# Breast Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult breast cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Breast Cancer

### Incidence and Mortality

Estimated new cases and deaths from breast cancer (women only) in the United States in 2025:[1]

- New cases: 316,950.
- Deaths: 42,170.

Breast cancer is the most common noncutaneous cancer in U.S. women, with an estimated 59,080 cases of female breast ductal carcinoma in situ (DCIS) and 316,950 cases of invasive disease in 2025.[1] About 42,170 women diagnosed with breast cancer—fewer than one in eight—will die of the disease. By comparison, about 60,540 American women will die of lung cancer in 2025.[1] Men account for 1% of breast cancer cases and breast cancer deaths. For more information, see the Special Populations section in Breast Cancer Screening.

Widespread adoption of screening increases breast cancer incidence in a given population and changes the characteristics of cancers detected, with increased incidence of lower-risk cancers, premalignant lesions, and DCIS. For more information, see the Ductal carcinoma in situ (DCIS) section in Breast Cancer Screening. Population studies from the United States [2] and the United Kingdom [3] demonstrate an increase in DCIS and invasive breast cancer incidence since the 1970s, attributable to the widespread adoption of both postmenopausal hormone therapy and screening mammography. In the last decade, women have refrained from using postmenopausal hormones, and breast cancer incidence has declined, but not to the levels seen before the widespread use of screening mammography.[4]

### Anatomy

Figure 1. Anatomy of the female breast. The nipple and areola are shown on the outside of the breast. The lymph nodes, lobes, lobules, ducts, and other parts of the inside of the breast are also shown.

Illustration of the female breast anatomy. On the left, a front view shows lymph nodes inside the breast going from the breast to the armpit. On the right, a cross-section shows the chest wall, ribs, fatty tissue, lobes, ducts, and lobules. Also shown in both panels are the muscle, nipple, and areola.

### Risk Factors

Increasing age is the most important risk factor for most cancers. Other risk factors for breast cancer include:

- Family health history.[5]
- Major inheritance susceptibility.[6,7]
  - Germline pathogenic variant of the BRCA1 and BRCA2 genes and other breast cancer susceptibility genes.[8,9]
- Alcohol intake.
- Breast tissue density (mammographic).[10]
- Estrogen (endogenous).[11-13]
  - Menstrual history (early menarche/late menopause).[14,15]
  - Nulliparity.
  - Older age at first birth.
- Hormone therapy history.
  - Combination estrogen plus progestin hormone replacement therapy.
- Obesity (postmenopausal).[16]
- Personal history of breast cancer.[17]
- Personal history of benign proliferative breast disease.[18-20]
- Radiation exposure to breast/chest.[21]

Age-specific risk estimates are available to help design screening strategies for women with and without a family history of breast cancer. The most commonly used tools include the Gail model (https://bcrisktool.cancer.gov/) and the IBIS/Tyrer-Cuzick model, version 8 (https://ems-trials.org/riskevaluator/) (which incorporates family history to a greater extent than the Gail model, as well as breast density).[22]

Of all women with breast cancer, 5% to 10% may have a germline pathogenic variant in the BRCA1 and BRCA2 genes.[23] Specific BRCA1 and BRCA2 variants are more common in women of Jewish ancestry.[24] In women with BRCA1 and BRCA2 pathogenic variants, the estimated lifetime risk of developing breast cancer is 40% to 85%. BRCA1 and BRCA2 carriers with a history of breast cancer have increased risk of contralateral disease that may be as high as 5% per year.[25] Men with BRCA1 and BRCA2 pathogenic variants also have increased breast cancer risk.[26]

BRCA1 and BRCA2 pathogenic variants also increase risk of ovarian cancer [26,27] and other primary cancers.[26,27] Once a BRCA1 or BRCA2 variant has been identified, other family members can be referred for genetic counseling and testing.[28-31]

For more information, see Genetics of Breast and Gynecologic Cancers, Breast Cancer Prevention, and Breast Cancer Screening.

### Protective Factors

The following protective factors and interventions reduce the risk of female breast cancer:

- Estrogen use (after hysterectomy).[32-34]
- Exercise.[35-37]
- Early pregnancy.[38-40]
- Breastfeeding.[41]
- Selective estrogen receptor modulators (SERMs).[42]
- Aromatase inhibitors or inactivators.[43,44]
- Risk-reducing mastectomy.[45]
- Risk-reducing oophorectomy or ovarian ablation.[46-49]

For more information about factors that decrease the risk of breast cancer, see Breast Cancer Prevention.

### Screening

Clinical trials have established that screening asymptomatic women using mammography, with or without clinical breast examination, decreases breast cancer mortality. For more information, see Breast Cancer Screening.

### Diagnosis

#### Patient evaluation

When breast cancer is suspected, patient management generally includes:

- Confirmation of the diagnosis.
- Evaluation of the stage of disease.
- Selection of therapy.

The following tests and procedures are used to diagnose breast cancer:

- Mammography.
- Ultrasonography.
- Breast magnetic resonance imaging (MRI), if clinically indicated.
- Biopsy.

#### Contralateral disease

Pathologically, breast cancer can be a multicentric and bilateral disease. Synchronous bilateral disease is somewhat more common in patients with infiltrating lobular carcinoma. At 10 years after diagnosis, the risk of a primary breast cancer in the contralateral breast ranges from 3% to 5%, although endocrine therapy decreases that risk.[50-53] The development of a contralateral breast cancer is associated with an increased risk of distant recurrence.[54] When patients with BRCA1 or BRCA2 pathogenic variants were diagnosed before age 40 years, the risk of a contralateral breast cancer reached nearly 50% in the ensuing 25 years.[55,56]

Patients who have breast cancer will undergo bilateral mammography at the time of diagnosis to rule out synchronous disease. To detect either recurrence in the ipsilateral breast in patients treated with breast-conserving surgery or a second primary cancer in the contralateral breast, patients will continue to have regular breast physical examinations and mammograms.

The role of MRI in screening the contralateral breast and monitoring women treated with breast-conserving therapy continues to evolve. Because an increased detection rate of mammographically occult disease has been demonstrated, the selective use of MRI for additional screening is occurring more frequently despite the absence of randomized, controlled data. Because only 25% of MRI-positive findings represent malignancy, pathological confirmation before treatment is recommended. Whether this increased detection rate will translate into improved treatment outcome is unknown.[57-59]

### Prognostic and Predictive Factors

Breast cancer is commonly treated by various combinations of surgery, radiation therapy, chemotherapy, and hormone therapy. Prognosis and selection of therapy may be influenced by the following clinical and pathological features (based on conventional histology and immunohistochemistry):[60]

- Menopausal status of the patient.
- Stage of the disease.
- Grade of the primary tumor.
- Estrogen receptor (ER) and progesterone receptor (PR) status of the tumor.
- Human epidermal growth factor type 2 receptor (HER2) overexpression and/or amplification.
- Histological type. Breast cancer is classified into a variety of histological types, some of which have prognostic importance. Favorable histological types include mucinous, medullary, and tubular carcinomas.[61-63] Histological type can impact the treatment approach, including locoregional management decision-making. For more information about lobular carcinoma, see the Histopathological Classification of Breast Cancer section.

The use of molecular profiling in breast cancer includes:[64]

- ER and PR status testing.
- HER2 receptor status testing.
- Gene profile testing by microarray assay or reverse transcription-polymerase chain reaction (e.g., MammaPrint, Oncotype DX, Breast Cancer Index [BCI]).

On the basis of ER, PR, and HER2 results, breast cancer is classified as one of the following types:

- Hormone receptor positive.
- HER2 positive.
- Triple negative (ER, PR, and HER2 negative).

ER, PR, and HER2 status are important in determining prognosis and in predicting response to endocrine and HER2-directed therapy. The American Society of Clinical Oncology/College of American Pathologists consensus panel has published guidelines to help standardize the performance, interpretation, and reporting of assays used to assess the ER-PR status by immunohistochemistry and HER2 status by immunohistochemistry and in situ hybridization.[65,66]

Gene profile tests include:

- MammaPrint: The first gene profile test to be approved by the U.S. Food and Drug Administration was the MammaPrint gene signature. The 70-gene signature classifies tumors into high- and low-risk prognostic categories.[67-71] The aim of the MINDACT (https://www.cancer.gov/clinicaltrials/NCT00433589) trial (NCT00433589) (see below) was to determine the clinical usefulness and patient benefit of adjuvant chemotherapy.
- Oncotype DX: The Oncotype DX 21 gene assay is the gene profile test with the most extensive clinical validation thus far and applies to HER2-negative hormone receptor–positive breast cancer. A 21-gene recurrence score is generated based on the level of expression of each of the 21 genes. This recurrence score informs prognosis and treatment decision-making.
  In the node-negative population, the designated risk groups are as follows:
  - Recurrence score ≤11: low risk. Chemotherapy is not indicated for this group.
  - Recurrence score >11 and ≤25: intermediate risk. Chemotherapy decision-making is complex and personalized for this group. Patient age ( ≤50 vs. >50 years), clinicopathological features, patient preference, and more are incorporated into this decision.
  - Recurrence score >25: high risk. Chemotherapy is indicated for this group.
  In the postmenopausal node-positive population, the designated risk groups are as follows:
  - Recurrence score ≤25: low risk. Chemotherapy is not indicated for this group.
  - Recurrence score >25: high risk. Chemotherapy is indicated for this group.

- BCI: The BCI is a combination of two profiles, the HOXB13/IL17BR expression ratio (H/I ratio) and the Molecular Grade Index. It has been both prognostic and predictive in patients with hormone receptor–positive breast cancer.

The following trials describe the prognostic and predictive value of multigene assays in early breast cancer:

1. The prognostic ability of the Oncotype DX 21-gene assay was assessed in two randomized trials.
  - The National Surgical Adjuvant Breast and Bowel Project (NSABP B-14 (http://www.nsabp.pitt.edu/B-14.asp)) trial randomly assigned patients to receive tamoxifen or placebo; the results favoring tamoxifen changed clinical practice in the late 1980s.[72] Formalin-fixed, paraffin-embedded tissue was available for 668 patients. The 10-year distant recurrence risk for patients treated with tamoxifen was 7% for those with a low recurrence score (defined in this trial as <18), 14% for those with an intermediate recurrence score (defined in this trial as 18–30), and 31% for those with high recurrence score (defined in this trial as ≥31) (P < .001).[73]
  - A community-based, case-control study examined the prognostic ability of the recurrence score to predict breast cancer deaths after 10 years in a group of tamoxifen-treated patients and observed a similar prognostic pattern to that seen in patients from NSABP B-14.[74]
2. The use of Oncotype Dx to predict benefit from chemotherapy in patients with node-negative, ER-positive breast cancer was initially assessed in a prospective-retrospective way using the tamoxifen alone (n = 227) and the combination arms (n = 424) of the NSABP B-20 (http://www.nsabp.pitt.edu/B-20.asp) trial.[72] Patients in the NSABP B-20 trial were randomly assigned to receive tamoxifen alone or tamoxifen concurrently with methotrexate and fluorouracil (MF) or cyclophosphamide with MF.[75]
  - The 10-year distant disease-free survival (DFS) improved from 60% to 88% by adding chemotherapy to tamoxifen in the high-risk group (defined in this trial as ≥31), while no benefit was observed in the low recurrence score group.[76]
3. Similar findings were reported in the prospective-retrospective evaluation of the SWOG-8814 (https://www.cancer.gov/clinicaltrials/NCT00929591) trial (NCT00929591) in hormone receptor–positive, lymph node–positive, postmenopausal patients treated with tamoxifen with or without cyclophosphamide, doxorubicin, and fluorouracil.[77] However, the sample size in this analysis was small, follow-up was only 5 years, and the prognostic impact of having positive nodes needs to be taken into consideration.
  - Of note, both analyses (NSABP B-20 and S8814) were underpowered for any conclusive predictive analysis among patients identified as having an intermediate recurrence score.
4. Results from the prospective, randomized TAILORx (https://www.cancer.gov/clinicaltrials/NCT00310180) trial (NCT00310180) indicate that chemotherapy is unlikely to provide substantial benefit to patients older than 50 years with ER-PR–positive and node-negative disease and a recurrence score of 11 to 25.[78] In this study, a low-risk score was defined as less than 11, an intermediate score was 11 to 25, and a high-risk score was greater than 25. These cut points differ from those described above.
  Patients in this study with a low-risk score were found to have very low rates of recurrence at 5 years with endocrine therapy.[79]
  - The invasive DFS (IDFS) rate was 93.8% at 5 years and 84.0% at 9 years.
  - The rate of freedom from recurrence of breast cancer at a distant site was 99.3% at 5 years and 96.8% at 9 years.
  - The rate of freedom from recurrence of breast cancer at a distant or local-regional site was 98.7% at 5 years and 95.0% at 9 years.
  - The overall survival (OS) rate was 98.0% at 5 years and 93.7% at 9 years.
  In the middle-risk group in the TAILORx study (recurrence score, 11–25), 6,907 women were randomly assigned to endocrine therapy alone or endocrine therapy plus chemotherapy.[78] Of these, 3,399 women on the endocrine therapy-alone arm and 3,312 women on the endocrine therapy-plus-chemotherapy arm were available for an analysis according to the randomized treatment assignments. After a median follow-up of 90 months, the difference in IDFS, the main study end point, met the prespecified noninferiority criterion (P > .10 for a test of no difference after 835 events had occurred) suggesting the noninferiority of endocrine therapy compared with endocrine therapy plus chemotherapy.
  - In this population, the 9-year IDFS rate was 83.3% for endocrine therapy alone and 84.3% for endocrine therapy plus chemotherapy (hazard ratio [HR], 1.08; 95% confidence interval [CI], 0.94–1.24; P = .26).[78][Level of evidence B1]
  - One hundred eighty-five patients in the endocrine-only arm received chemotherapy, and 608 patients in the endocrine therapy-plus-chemotherapy arm did not receive their assigned chemotherapy. In an analysis based on the actual treatment received, the HR for IDFS was 1.14 (95% CI, 0.99–1.31; P = .06).
  - Outcomes for the other end points examined (freedom of distant breast cancer recurrence, freedom from local and distant recurrence, and OS) were similar between the two treatment arms and none were significant at P < .10.
  - There was a significant interaction between treatment assignment and age (P = .03) with respect to IDFS, suggesting that chemotherapy might be beneficial in women younger than 50 years with recurrence scores ranging from 11 to 25.
  - A secondary analysis of TAILORx demonstrated that integration of clinical risk (assessed by tumor size and grade) adds prognostic information to the recurrence score in women with a recurrence score of at least 11; however, clinical risk was not predictive of a chemotherapy benefit.[80] This secondary analysis further explored the interaction between age and chemotherapy benefit. Among women aged 50 years or younger, rates of distant recurrence were lower with chemotherapy for patients with recurrence scores of 16 to 20 and high clinical risk. Rates were also lower for patients with recurrence scores of 21 to 25, regardless of clinical risk.
  - Most women received tamoxifen as their endocrine therapy. It is not certain if any of the observed benefits of chemotherapy are attributable to ovarian function suppression and if they could be achieved through endocrine therapy.
5. The MINDACT (https://www.cancer.gov/clinicaltrials/NCT00433589) trial (NCT00433589) tested whether adding MammaPrint genomic risk to a clinical-risk classification (modified from Adjuvant! Online) might guide more appropriate choices of chemotherapy in women with node negative- or 1-to-3 node-positive disease.[81][Level of evidence C2] Unlike the TAILORx study, which only had hormone receptor–positive patients, this trial included hormone receptor–negative patients. In this prospective study, women with both genomic and clinical high-risk classification received chemotherapy, while those with both genomic and clinical low-risk classification did not receive chemotherapy. Participants with discordant results (clinical high-risk- with genomic low-risk classification, or clinical low-risk- with genomic high-risk classification) were randomly assigned to receive or not receive chemotherapy. A total of 1,550 women with high clinical risk and low genomic risk, and 592 women with low clinical risk and high genomic risk, were randomly assigned to receive or not receive chemotherapy. The primary goal of the study was to determine whether patients with high clinical risk, but low genomic risk, who did not receive chemotherapy had a 5-year survival rate without distant metastases (primary study end point) of 92% or lower (a noninferiority design).
  - This end point was met because the observed rate in the group was 94.7% (95% CI, 92.5%–96.2%). However, among patients with high clinical risk but low genomic risk, the rate of 5-year survival without distant metastases was 1.5% higher in the arm that did receive chemotherapy than in the arm that did not receive chemotherapy, although the study was not powered to detect a difference between these arms (HR chemotherapy vs. no chemotherapy, 0.78; 95% CI, 0.50–1.21; P = .27)
  - Patients in the low clinical risk group with high genomic risk did well, and there was little evidence of benefit from chemotherapy in this group (5-year survival without distant metastases, 95.8% with chemotherapy vs. 95.0% without; HR, 1.17; 95% CI, 0.59–2.28; P = .66).
6. The RxPONDER (https://www.cancer.gov/clinicaltrials/NCT01272037) trial (NCT01272037) included 3,350 postmenopausal and 1,665 premenopausal women with HER2-negative hormone receptor–positive breast cancer who had a recurrence score of 25 or less. Patients were randomly assigned to receive either endocrine therapy alone or endocrine therapy plus chemotherapy. Results have been reported in abstract form; the primary study end point was IDFS. Because a prespecified test for interaction between treatment assignment and menopausal status was significant (P = .004), the premenopausal and postmenopausal groups were analyzed separately.[82]
  - In postmenopausal patients, there was no evidence of a benefit with the addition of chemotherapy (HR for endocrine therapy plus chemotherapy vs. endocrine therapy, 0.97; 95% CI, 0.78–1.22; 5-year IDFS rate, 91.6% vs. 91.9%; P = .82).[82][Level of evidence B1]
  - In premenopausal patients, however, there was evidence of a benefit from the addition of chemotherapy to endocrine therapy (HR, 0.54; 95% CI, 0.38–0.76; 5-year IDFS rate, 94.2% vs. 89.0%; P = .0004). OS was also significantly improved in patients who received endocrine therapy plus chemotherapy (HR, 0.47; 95% CI, 0.24–0.94; P = .032).[Level of evidence A1]
7. The West German Study Group Plan B (https://www.cancer.gov/clinicaltrials/NCT01049425) trial (NCT01049425) compared two chemotherapy regimens in patients with node-positive (pN1) or high-risk node-negative disease. Chemotherapy was not offered to patients with recurrence scores below 12, but they were followed. For a full description of the chemotherapy regimens, see Postoperative systemic therapy for HER2-negative hormone receptor–positive breast cancer.
  - The 5-year DFS rates were very high in the 348 patients who did not receive chemotherapy and did not differ between node-negative patients (94.5%) and pN1 patients (94.9%).[83][Level of evidence C1]
8. The prognostic ability of the BCI has been described in multiple trials.[84-86]
  - The H/I expression ratio has been shown to predict DFS in patients with tamoxifen-treated, hormone receptor–positive, node-negative breast cancer.[84]
  - The prognostic ability of the H/I ratio regarding late recurrence and treatment benefit was evaluated in the MA.17 trial. A high H/I ratio was statistically significantly associated with a decrease in late recurrence in patients who received extended letrozole therapy compared with those who did not (odds ratio, 0.35; 95% CI, 0.16–0.75; P = .007).[85]
  - In a secondary analysis of the ATAC trial, the BCI was prognostic in patients with node-negative breast cancer for both early (years 0–5) and late (years 5–10) distant recurrence. For patients with stage I HER2-negative hormone receptor–positive tumors, a high H/I ratio predicted significant rates of late distant recurrence.[86]
9. The BCI has also been evaluated for predictive capability.[87]
  - The BCI H/I ratio was evaluated for its ability to predict benefit from extended endocrine therapy in patients who participated in the aTTom (https://www.cancer.gov/clinicaltrials/NCT00003678) trial (NCT00003678). A BCI H/I-high designation was predictive of endocrine response. A subset of patients with hormone receptor–positive, node-positive disease had significant benefit from 10 years (versus 5 years) of tamoxifen therapy. Patients with a BCI H/I-low designation showed no significant benefit from extended endocrine therapy.[87]
  - The BCI H/I ratio was evaluated as a predictive biomarker of extended endocrine therapy benefit in patients from the IDEAL trial. Tumor specimens from 908 patients randomly assigned to receive 2.5 years versus 5 years of extended letrozole were evaluated using the BCI. A BCI H/I-high designation significantly predicted benefit from extended aromatase inhibitor therapy, whereas patients with a BCI H/I-low designation did not derive significant benefit.[88]

Many other gene-based assays may guide treatment decisions in patients with early breast cancer (e.g., Predictor Analysis of Microarray 50 [PAM50] Risk of Recurrence score, EndoPredict).

Although certain rare inherited variants (like BRCA1 and BRCA2 variants) predispose women to breast cancer, prognostic data on BRCA1/BRCA2 carriers who developed breast cancer are conflicting. These women are at greater risk of developing contralateral breast cancer. For more information, see the Female Breast Cancer Risks section in BRCA1 and BRCA2: Cancer Risks and Management.

### Posttherapy Considerations

#### Hormone replacement therapy

After careful consideration, certain patients with severe symptoms may be treated with hormone replacement therapy. For more information, see the Hormone Replacement Therapy section in Hot Flashes and Night Sweats and Breast Cancer Prevention.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Altekruse SF, Kosary CL, Krapcho M, et al.: SEER Cancer Statistics Review, 1975-2007. National Cancer Institute, 2010. Also available online (http://seer.cancer.gov/archive/csr/1975_2007/). Last accessed April 24, 2025.
Johnson A, Shekhdar J: Breast cancer incidence: what do the figures mean? J Eval Clin Pract 11 (1): 27-31, 2005.15660534
Haas JS, Kaplan CP, Gerstenberger EP, et al.: Changes in the use of postmenopausal hormone therapy after the publication of clinical trial results. Ann Intern Med 140 (3): 184-8, 2004.14757616
Colditz GA, Kaphingst KA, Hankinson SE, et al.: Family history and risk of breast cancer: nurses' health study. Breast Cancer Res Treat 133 (3): 1097-104, 2012.22350789
Malone KE, Daling JR, Doody DR, et al.: Family history of breast cancer in relation to tumor characteristics and mortality in a population-based study of young women with invasive breast cancer. Cancer Epidemiol Biomarkers Prev 20 (12): 2560-71, 2011.21960690
Cybulski C, Wokołorczyk D, Jakubowska A, et al.: Risk of breast cancer in women with a CHEK2 mutation with and without a family history of breast cancer. J Clin Oncol 29 (28): 3747-52, 2011.21876083
Goodwin PJ, Phillips KA, West DW, et al.: Breast cancer prognosis in BRCA1 and BRCA2 mutation carriers: an International Prospective Breast Cancer Family Registry population-based cohort study. J Clin Oncol 30 (1): 19-26, 2012.22147742
Mavaddat N, Barrowdale D, Andrulis IL, et al.: Pathology of breast and ovarian cancers among BRCA1 and BRCA2 mutation carriers: results from the Consortium of Investigators of Modifiers of BRCA1/2 (CIMBA). Cancer Epidemiol Biomarkers Prev 21 (1): 134-47, 2012.22144499
Razzaghi H, Troester MA, Gierach GL, et al.: Mammographic density and breast cancer risk in White and African American Women. Breast Cancer Res Treat 135 (2): 571-80, 2012.22864770
Key TJ, Appleby PN, Reeves GK, et al.: Circulating sex hormones and breast cancer risk factors in postmenopausal women: reanalysis of 13 studies. Br J Cancer 105 (5): 709-22, 2011.21772329
Kaaks R, Rinaldi S, Key TJ, et al.: Postmenopausal serum androgens, oestrogens and breast cancer risk: the European prospective investigation into cancer and nutrition. Endocr Relat Cancer 12 (4): 1071-82, 2005.16322344
Kaaks R, Berrino F, Key T, et al.: Serum sex steroids in premenopausal women and breast cancer risk within the European Prospective Investigation into Cancer and Nutrition (EPIC). J Natl Cancer Inst 97 (10): 755-65, 2005.15900045
Collaborative Group on Hormonal Factors in Breast Cancer: Menarche, menopause, and breast cancer risk: individual participant meta-analysis, including 118 964 women with breast cancer from 117 epidemiological studies. Lancet Oncol 13 (11): 1141-51, 2012.23084519
Ritte R, Lukanova A, Tjønneland A, et al.: Height, age at menarche and risk of hormone receptor-positive and -negative breast cancer: a cohort study. Int J Cancer 132 (11): 2619-29, 2013.23090881
Wolin KY, Carson K, Colditz GA: Obesity and cancer. Oncologist 15 (6): 556-65, 2010.20507889
Kotsopoulos J, Chen WY, Gates MA, et al.: Risk factors for ductal and lobular breast cancer: results from the nurses' health study. Breast Cancer Res 12 (6): R106, 2010.21143857
Goldacre MJ, Abisgold JD, Yeates DG, et al.: Benign breast disease and subsequent breast cancer: English record linkage studies. J Public Health (Oxf) 32 (4): 565-71, 2010.20154063
Kabat GC, Jones JG, Olson N, et al.: A multi-center prospective cohort study of benign breast disease and risk of subsequent breast cancer. Cancer Causes Control 21 (6): 821-8, 2010.20084540
Worsham MJ, Raju U, Lu M, et al.: Risk factors for breast cancer from benign breast disease in a diverse population. Breast Cancer Res Treat 118 (1): 1-7, 2009.18836828
Travis LB, Hill DA, Dores GM, et al.: Breast cancer following radiotherapy and chemotherapy among young women with Hodgkin disease. JAMA 290 (4): 465-75, 2003.12876089
Tyrer J, Duffy SW, Cuzick J: A breast cancer prediction model incorporating familial and personal risk factors. Stat Med 23 (7): 1111-30, 2004.15057881
Blackwood MA, Weber BL: BRCA1 and BRCA2: from molecular genetics to clinical medicine. J Clin Oncol 16 (5): 1969-77, 1998.9586917 98246329
Offit K, Gilewski T, McGuire P, et al.: Germline BRCA1 185delAG mutations in Jewish women with breast cancer. Lancet 347 (9016): 1643-5, 1996.8642955 96238765
Frank TS, Manley SA, Olopade OI, et al.: Sequence analysis of BRCA1 and BRCA2: correlation of mutations with family history and ovarian cancer risk. J Clin Oncol 16 (7): 2417-25, 1998.9667259 98329833
Cancer risks in BRCA2 mutation carriers. The Breast Cancer Linkage Consortium. J Natl Cancer Inst 91 (15): 1310-6, 1999.10433620 99362511
Ford D, Easton DF, Bishop DT, et al.: Risks of cancer in BRCA1-mutation carriers. Breast Cancer Linkage Consortium. Lancet 343 (8899): 692-5, 1994.7907678 94180617
Biesecker BB, Boehnke M, Calzone K, et al.: Genetic counseling for families with inherited susceptibility to breast and ovarian cancer. JAMA 269 (15): 1970-4, 1993.8352830 93218062
Berry DA, Parmigiani G, Sanchez J, et al.: Probability of carrying a mutation of breast-ovarian cancer gene BRCA1 based on family history. J Natl Cancer Inst 89 (3): 227-38, 1997.9017003 97169196
Hoskins KF, Stopfer JE, Calzone KA, et al.: Assessment and counseling for women with a family history of breast cancer. A guide for clinicians. JAMA 273 (7): 577-85, 1995.7837392 95139201
Statement of the American Society of Clinical Oncology: genetic testing for cancer susceptibility, Adopted on February 20, 1996. J Clin Oncol 14 (5): 1730-6; discussion 1737-40, 1996.8622094 96208855
Anderson GL, Limacher M, Assaf AR, et al.: Effects of conjugated equine estrogen in postmenopausal women with hysterectomy: the Women's Health Initiative randomized controlled trial. JAMA 291 (14): 1701-12, 2004.15082697
LaCroix AZ, Chlebowski RT, Manson JE, et al.: Health outcomes after stopping conjugated equine estrogens among postmenopausal women with prior hysterectomy: a randomized controlled trial. JAMA 305 (13): 1305-14, 2011.21467283
Anderson GL, Chlebowski RT, Aragaki AK, et al.: Conjugated equine oestrogen and breast cancer incidence and mortality in postmenopausal women with hysterectomy: extended follow-up of the Women's Health Initiative randomised placebo-controlled trial. Lancet Oncol 13 (5): 476-86, 2012.22401913
Bernstein L, Henderson BE, Hanisch R, et al.: Physical exercise and reduced risk of breast cancer in young women. J Natl Cancer Inst 86 (18): 1403-8, 1994.8072034 94351760
Thune I, Brenn T, Lund E, et al.: Physical activity and the risk of breast cancer. N Engl J Med 336 (18): 1269-75, 1997.9113929 97258685
Adams-Campbell LL, Rosenberg L, Rao RS, et al.: Strenuous physical activity and breast cancer risk in African-American women. J Natl Med Assoc 93 (7-8): 267-75, 2001 Jul-Aug.11491277 21383360
Kampert JB, Whittemore AS, Paffenbarger RS: Combined effect of childbearing, menstrual events, and body size on age-specific breast cancer risk. Am J Epidemiol 128 (5): 962-79, 1988.3189296 89047366
Pike MC, Krailo MD, Henderson BE, et al.: 'Hormonal' risk factors, 'breast tissue age' and the age-incidence of breast cancer. Nature 303 (5920): 767-70, 1983.6866078 83244959
Lambe M, Hsieh C, Trichopoulos D, et al.: Transient increase in the risk of breast cancer after giving birth. N Engl J Med 331 (1): 5-9, 1994.8202106 94261144
Col: Breast cancer and breastfeeding: collaborative reanalysis of individual data from 47 epidemiological studies in 30 countries, including 50302 women with breast cancer and 96973 women without the disease. Lancet 360 (9328): 187-95, 2002.12133652 22129315
Cuzick J, Sestak I, Bonanni B, et al.: Selective oestrogen receptor modulators in prevention of breast cancer: an updated meta-analysis of individual participant data. Lancet 381 (9880): 1827-34, 2013.23639488
Goss PE, Ingle JN, Alés-Martínez JE, et al.: Exemestane for breast-cancer prevention in postmenopausal women. N Engl J Med 364 (25): 2381-91, 2011.21639806
Cuzick J, Sestak I, Forbes JF, et al.: Anastrozole for prevention of breast cancer in high-risk postmenopausal women (IBIS-II): an international, double-blind, randomised placebo-controlled trial. Lancet 383 (9922): 1041-8, 2014.24333009
Hartmann LC, Schaid DJ, Woods JE, et al.: Efficacy of bilateral prophylactic mastectomy in women with a family history of breast cancer. N Engl J Med 340 (2): 77-84, 1999.9887158 99091091
Rebbeck TR, Levin AM, Eisen A, et al.: Breast cancer risk after bilateral prophylactic oophorectomy in BRCA1 mutation carriers. J Natl Cancer Inst 91 (17): 1475-9, 1999.10469748 99400811
Kauff ND, Satagopan JM, Robson ME, et al.: Risk-reducing salpingo-oophorectomy in women with a BRCA1 or BRCA2 mutation. N Engl J Med 346 (21): 1609-15, 2002.12023992 22022073
Rebbeck TR, Lynch HT, Neuhausen SL, et al.: Prophylactic oophorectomy in carriers of BRCA1 or BRCA2 mutations. N Engl J Med 346 (21): 1616-22, 2002.12023993 22022074
Kauff ND, Domchek SM, Friebel TM, et al.: Risk-reducing salpingo-oophorectomy for the prevention of BRCA1- and BRCA2-associated breast and gynecologic cancer: a multicenter, prospective study. J Clin Oncol 26 (8): 1331-7, 2008.18268356
Rosen PP, Groshen S, Kinne DW, et al.: Factors influencing prognosis in node-negative breast carcinoma: analysis of 767 T1N0M0/T2N0M0 patients with long-term follow-up. J Clin Oncol 11 (11): 2090-100, 1993.8229123 94045812
Abbott A, Rueth N, Pappas-Varco S, et al.: Perceptions of contralateral breast cancer: an overestimation of risk. Ann Surg Oncol 18 (11): 3129-36, 2011.21947590
Nichols HB, Berrington de González A, Lacey JV, et al.: Declining incidence of contralateral breast cancer in the United States from 1975 to 2006. J Clin Oncol 29 (12): 1564-9, 2011.21402610
Giannakeas V, Lim DW, Narod SA: The risk of contralateral breast cancer: a SEER-based analysis. Br J Cancer 125 (4): 601-610, 2021.34040177
Heron DE, Komarnicky LT, Hyslop T, et al.: Bilateral breast carcinoma: risk factors and outcomes for patients with synchronous and metachronous disease. Cancer 88 (12): 2739-50, 2000.10870056 20329855
Graeser MK, Engel C, Rhiem K, et al.: Contralateral breast cancer risk in BRCA1 and BRCA2 mutation carriers. J Clin Oncol 27 (35): 5887-92, 2009.19858402
Garber JE, Golshan M: Contralateral breast cancer in BRCA1/BRCA2 mutation carriers: the story of the other side. J Clin Oncol 27 (35): 5862-4, 2009.19858367
Lehman CD, Gatsonis C, Kuhl CK, et al.: MRI evaluation of the contralateral breast in women with recently diagnosed breast cancer. N Engl J Med 356 (13): 1295-303, 2007.17392300
Solin LJ, Orel SG, Hwang WT, et al.: Relationship of breast magnetic resonance imaging to outcome after breast-conservation treatment with radiation for women with early-stage invasive breast carcinoma or ductal carcinoma in situ. J Clin Oncol 26 (3): 386-91, 2008.18202414
Morrow M: Magnetic resonance imaging in the breast cancer patient: curb your enthusiasm. J Clin Oncol 26 (3): 352-3, 2008.18202408
Simpson JF, Gray R, Dressler LG, et al.: Prognostic value of histologic grade and proliferative activity in axillary node-positive breast cancer: results from the Eastern Cooperative Oncology Group Companion Study, EST 4189. J Clin Oncol 18 (10): 2059-69, 2000.10811671 20271995
Rosen PP, Groshen S, Kinne DW: Prognosis in T2N0M0 stage I breast carcinoma: a 20-year follow-up study. J Clin Oncol 9 (9): 1650-61, 1991.1875222 91341532
Diab SG, Clark GM, Osborne CK, et al.: Tumor characteristics and clinical outcome of tubular and mucinous breast carcinomas. J Clin Oncol 17 (5): 1442-8, 1999.10334529
Rakha EA, Lee AH, Evans AJ, et al.: Tubular carcinoma of the breast: further evidence to support its excellent prognosis. J Clin Oncol 28 (1): 99-104, 2010.19917872
Sørlie T, Perou CM, Tibshirani R, et al.: Gene expression patterns of breast carcinomas distinguish tumor subclasses with clinical implications. Proc Natl Acad Sci U S A 98 (19): 10869-74, 2001.11553815
Wolff AC, Somerfield MR, Dowsett M, et al.: Human Epidermal Growth Factor Receptor 2 Testing in Breast Cancer: ASCO-College of American Pathologists Guideline Update. J Clin Oncol 41 (22): 3867-3872, 2023.37284804
Allison KH, Hammond MEH, Dowsett M, et al.: Estrogen and Progesterone Receptor Testing in Breast Cancer: ASCO/CAP Guideline Update. J Clin Oncol 38 (12): 1346-1366, 2020.31928404
Buyse M, Loi S, van't Veer L, et al.: Validation and clinical utility of a 70-gene prognostic signature for women with node-negative breast cancer. J Natl Cancer Inst 98 (17): 1183-92, 2006.16954471
Wittner BS, Sgroi DC, Ryan PD, et al.: Analysis of the MammaPrint breast cancer assay in a predominantly postmenopausal cohort. Clin Cancer Res 14 (10): 2988-93, 2008.18483364
Mook S, Knauer M, Bueno-de-Mesquita JM, et al.: Metastatic potential of T1 breast cancer can be predicted by the 70-gene MammaPrint signature. Ann Surg Oncol 17 (5): 1406-13, 2010.20094918
Ishitobi M, Goranova TE, Komoike Y, et al.: Clinical utility of the 70-gene MammaPrint profile in a Japanese population. Jpn J Clin Oncol 40 (6): 508-12, 2010.20110242
Knauer M, Mook S, Rutgers EJ, et al.: The predictive value of the 70-gene signature for adjuvant chemotherapy in early breast cancer. Breast Cancer Res Treat 120 (3): 655-61, 2010.20204499
Fisher B, Jeong JH, Bryant J, et al.: Treatment of lymph-node-negative, oestrogen-receptor-positive breast cancer: long-term findings from National Surgical Adjuvant Breast and Bowel Project randomised clinical trials. Lancet 364 (9437): 858-68, 2004.15351193
Paik S, Shak S, Tang G, et al.: A multigene assay to predict recurrence of tamoxifen-treated, node-negative breast cancer. N Engl J Med 351 (27): 2817-26, 2004.15591335
Habel LA, Shak S, Jacobs MK, et al.: A population-based study of tumor gene expression and risk of breast cancer death among lymph node-negative patients. Breast Cancer Res 8 (3): R25, 2006.16737553
Mamounas EP, Tang G, Fisher B, et al.: Association between the 21-gene recurrence score assay and risk of locoregional recurrence in node-negative, estrogen receptor-positive breast cancer: results from NSABP B-14 and NSABP B-20. J Clin Oncol 28 (10): 1677-83, 2010.20065188
Paik S, Tang G, Shak S, et al.: Gene expression and benefit of chemotherapy in women with node-negative, estrogen receptor-positive breast cancer. J Clin Oncol 24 (23): 3726-34, 2006.16720680
Albain KS, Barlow WE, Shak S, et al.: Prognostic and predictive value of the 21-gene recurrence score assay in postmenopausal women with node-positive, oestrogen-receptor-positive breast cancer on chemotherapy: a retrospective analysis of a randomised trial. Lancet Oncol 11 (1): 55-65, 2010.20005174
Sparano JA, Gray RJ, Makower DF, et al.: Adjuvant Chemotherapy Guided by a 21-Gene Expression Assay in Breast Cancer. N Engl J Med 379 (2): 111-121, 2018.29860917
Sparano JA, Gray RJ, Makower DF, et al.: Prospective Validation of a 21-Gene Expression Assay in Breast Cancer. N Engl J Med 373 (21): 2005-14, 2015.26412349
Sparano JA, Gray RJ, Ravdin PM, et al.: Clinical and Genomic Risk to Guide the Use of Adjuvant Therapy for Breast Cancer. N Engl J Med 380 (25): 2395-2405, 2019.31157962
Cardoso F, van't Veer LJ, Bogaerts J, et al.: 70-Gene Signature as an Aid to Treatment Decisions in Early-Stage Breast Cancer. N Engl J Med 375 (8): 717-29, 2016.27557300
Kalinsky K, Barlow WE, Meric-Bernstam F, et al.: Abstract GS3-00: first results from a phase III randomized clinical trial of standard adjuvant endocrine therapy (ET) +/- chemotherapy (CT) in patients (pts) with 1-3 positive nodes, hormone receptor-positive (HR+) and HER2-negative (HER2-) breast cancer (BC) with recurrence score (RS) < 25: SWOG S1007 (RxPonder). [Abstract] Cancer Res 81 (4): A-GS3-00, 2021. Also available online (https://cancerres.aacrjournals.org/content/81/4_Supplement/GS3-00). Last accessed April 24, 2025.
Nitz U, Gluz O, Clemens M, et al.: West German Study PlanB Trial: Adjuvant Four Cycles of Epirubicin and Cyclophosphamide Plus Docetaxel Versus Six Cycles of Docetaxel and Cyclophosphamide in HER2-Negative Early Breast Cancer. J Clin Oncol 37 (10): 799-808, 2019.30785826
Ma XJ, Wang Z, Ryan PD, et al.: A two-gene expression ratio predicts clinical outcome in breast cancer patients treated with tamoxifen. Cancer Cell 5 (6): 607-16, 2004.15193263
Sgroi DC, Carney E, Zarrella E, et al.: Prediction of late disease recurrence and extended adjuvant letrozole benefit by the HOXB13/IL17BR biomarker. J Natl Cancer Inst 105 (14): 1036-42, 2013.23812955
Sgroi DC, Sestak I, Cuzick J, et al.: Prediction of late distant recurrence in patients with oestrogen-receptor-positive breast cancer: a prospective comparison of the breast-cancer index (BCI) assay, 21-gene recurrence score, and IHC4 in the TransATAC study population. Lancet Oncol 14 (11): 1067-1076, 2013.24035531
Bartlett JMS, Sgroi DC, Treuner K, et al.: Breast Cancer Index and prediction of benefit from extended endocrine therapy in breast cancer patients treated in the Adjuvant Tamoxifen-To Offer More? (aTTom) trial. Ann Oncol 30 (11): 1776-1783, 2019.31504126
Noordhoek I, Treuner K, Putter H, et al.: Breast Cancer Index Predicts Extended Endocrine Benefit to Individualize Selection of Patients with HR+ Early-stage Breast Cancer for 10 Years of Endocrine Therapy. Clin Cancer Res 27 (1): 311-319, 2021.33109739

## Histopathological Classification of Breast Cancer

Table 1 describes the histological classification of breast cancer based on tumor location.[1] Infiltrating or invasive ductal cancer is the most common breast cancer histological type and comprises 70% to 80% of all cases.

Table 1. Tumor Location and Related Histological Subtype

Tumor Location | Histological Subtype
Carcinoma, NOS
Ductal | Intraductal (in situ)
Ductal | Invasive with predominant component
Ductal | Invasive, NOS
Ductal | Comedo
Ductal | Inflammatory
Ductal | Medullary with lymphocytic infiltrate
Ductal | Mucinous (colloid)
Ductal | Papillary
Ductal | Scirrhous
Ductal | Tubular
Ductal | Other
Lobular | Invasive with predominant in situ component
Lobular | Invasive [2,3]
Nipple | Paget disease, NOS
Nipple | Paget disease with intraductal carcinoma
Nipple | Paget disease with invasive ductal carcinoma
Other | Undifferentiated carcinoma
Other | Metaplastic

NOS = not otherwise specified.

Lobular carcinoma is the second most common breast cancer histological type, comprising 10% to 15% of all cases. Lobular carcinoma has characteristics that define a natural history distinct from that of ductal carcinoma (see Figure 2).

Figure 2. The differences between invasive lobular carcinoma (ILC) tumor cells and invasive ductal carcinoma (IDC) tumor cells. Reprinted with permission from the Lobular Breast Cancer Alliance (https://lobularbreastcancer.org/).

Graphic showing the differences between invasive lobular carcinoma tumor cells and invasive ductal carcinoma cells.

This cellular distinction leads to variation in imaging modality utility, pathological diagnostic criteria, metastatic pattern of spread, timing of metastatic presentation, and sensitivity to antineoplastic therapeutics. Lobular carcinoma characteristics include, but are not limited to, the following:[3]

- Absence of E-cadherin expression, which can lead to a more linear, rather than mass-like, growth pattern. This pattern can make mammography less sensitive and increases breast magnetic resonance imaging utility in assessing extent of disease in the breast.
- Less usual patterns of metastatic spread, including, but not limited to, pleural, gastrointestinal, genitourinary, and peritoneal metastatic involvement.
- Higher likelihood of estrogen-receptor expression.
- Lower sensitivity of positron emission tomography (PET) imaging for detection of disease. Compared with ductal carcinoma, lobular carcinoma has a lower level of fluorine F 18-fludeoxyglucose (18F-FDG) uptake on PET and is detected at a significantly lower sensitivity.[4-6]
  - One series demonstrated a mean maximum standard uptake value of 18F-FDG in invasive lobular carcinoma (1.99 ± 1.72) that was significantly lower compared with invasive ductal carcinoma (3.91 ± 3.99) (P = .032).[4,5]
  - In another series, the relative risk of PET-computed tomography revealing unsuspected distant metastases in patients with stage III invasive ductal carcinoma was 1.98 times (95% confidence interval, 0.98–3.98) that of patients with stage III invasive lobular carcinoma (P = .049).[6]
- More frequent diagnoses at later stages and a greater likelihood of lymph node involvement.

The following tumor subtypes occur in the breast but are not considered typical breast cancers:

- Phyllodes tumor.[7,8]
- Angiosarcoma.
- Primary lymphoma.

### References

Breast. In: Edge SB, Byrd DR, Compton CC, et al., eds.: AJCC Cancer Staging Manual. 7th ed. Springer, 2010, pp 347-76.
Yeatman TJ, Cantor AB, Smith TJ, et al.: Tumor biology of infiltrating lobular carcinoma. Implications for management. Ann Surg 222 (4): 549-59; discussion 559-61, 1995.7574934 96025125
Oesterreich S, Nasrazadani A, Zou J, et al.: Clinicopathological Features and Outcomes Comparing Patients With Invasive Ductal and Lobular Breast Cancer. J Natl Cancer Inst 114 (11): 1511-1522, 2022.36239760
Fujii T, Yajima R, Kurozumi S, et al.: Clinical Significance of 18F-FDG-PET in Invasive Lobular Carcinoma. Anticancer Res 36 (10): 5481-5485, 2016.27798919
Jung NY, Kim SH, Choi BB, et al.: Associations between the standardized uptake value of (18)F-FDG PET/CT and the prognostic factors of invasive lobular carcinoma: in comparison with invasive ductal carcinoma. World J Surg Oncol 13: 113, 2015.25889560
Hogan MP, Goldman DA, Dashevsky B, et al.: Comparison of 18F-FDG PET/CT for Systemic Staging of Newly Diagnosed Invasive Lobular Carcinoma Versus Invasive Ductal Carcinoma. J Nucl Med 56 (11): 1674-80, 2015.26294295
Chaney AW, Pollack A, McNeese MD, et al.: Primary treatment of cystosarcoma phyllodes of the breast. Cancer 89 (7): 1502-11, 2000.11013364 20469242
Carter BA, Page DL: Phyllodes tumor of the breast: local recurrence versus metastatic capacity. Hum Pathol 35 (9): 1051-2, 2004.15343504

## Stage Information for Breast Cancer

The American Joint Committee on Cancer (AJCC) staging system provides a strategy for grouping patients with respect to prognosis. Therapeutic decisions are formulated in part according to staging categories but also other clinical factors such as the following, some of which are included in the determination of stage:

- Tumor size.
- Lymph node status.
- Estrogen-receptor and progesterone-receptor levels in the tumor tissue.
- Human epidermal growth factor receptor 2 (HER2) status in the tumor.
- Tumor grade.
- Menopausal status.
- General health of the patient.

The standards used to define biomarker status are described as follows:

- Estrogen receptor (ER) expression: ER expression is measured primarily by immunohistochemistry (IHC). Any staining of 1% of cells or more is considered positive for ER.[1]
- Progesterone receptor (PR) expression: PR expression is measured primarily by IHC. Any staining of 1% of cells or more is considered positive for PR.
- HER2 expression: HER2 is measured primarily by either IHC to assess expression of the HER2 protein or by in situ hybridization (ISH) to assess gene copy number. The American Society of Clinical Oncology/College of American Pathologists consensus panel has published guidelines for cases when either IHC or ISH testing is equivocal.[2]
  IHC:
  - Negative: 0 or 1+ staining
  - Equivocal: 2+ staining
  - Positive: 3+ staining
  ISH (dual probe):
  - Possible negative results:
    - HER2/chromosome enumeration probe (CEP17) ratio <2.0 AND HER2 copy number <4
  - Possible equivocal results: (requires performing alternative ISH test to confirm equivocal or IHC if not previously performed)
    - HER2/CEP17 ratio <2.0 AND HER2 copy number ≥4 but <6
  - Possible positive results:
    - HER2/CEP17 ratio ≥2.0 by ISH
    - HER2 copy number ≥6 regardless of ratio by ISH
  ISH (single probe):
  - Negative: <4 HER2 copies
  - Equivocal: ≥4 but <6 HER2 copies
  - Positive: ≥6 HER2 copies

### TNM Definitions

The AJCC has designated staging by TNM (tumor, node, metastasis) classification to define breast cancer.[3] The grade of the tumor is determined by its morphologic features, such as tubule formation, nuclear pleomorphism, and mitotic count.

Table 2. Definition of Primary Tumor (T) – Clinical and Pathological^a^

T Category | T Criteria
TX | Primary tumor cannot be assessed.
T0 | No evidence of primary tumor.
Tis^b^ | DCIS.
Tis (Paget) | Paget disease of the nipple NOT associated with invasive carcinoma and/or DCIS in the underlying breast parenchyma. Carcinomas in the breast parenchyma associated with Paget disease are categorized based on the size and characteristics of the parenchymal disease, although the presence of Paget disease should still be noted.
T1 | Tumor ≤20 mm in greatest dimension.
–T1mi | Tumor ≤1 mm in greatest dimension.
–T1a | Tumor >1 mm but ≤5 mm in greatest dimension (round any measurement >1.0–1.9 mm to 2 mm).
–T1b | Tumor >5 mm but ≤10 mm in greatest dimension.
–T1c | Tumor >10 mm but ≤20 mm in greatest dimension.
T2 | Tumor >20 mm but ≤50 mm in greatest dimension.
T3 | Tumor >50 mm in greatest dimension.
T4 | Tumor of any size with direct extension to the chest wall and/or to the skin (ulceration or macroscopic nodules); invasion of the dermis alone does not qualify as T4.
–T4a | Extension to the chest wall; invasion or adherence to pectoralis muscle in the absence of invasion of chest wall structures does not qualify as T4.
–T4b | Ulceration and/or ipsilateral macroscopic satellite nodules and/or edema (including peau d'orange) of the skin that does not meet the criteria for inflammatory carcinoma.
–T4c | Both T4a and T4b are present.
–T4d | Inflammatory carcinoma (see Rules for Classification^c^).

DCIS = ductal carcinoma in situ.

^a^Reprinted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

^b^Lobular carcinoma in situ is a benign entity and is removed from TNM staging in the AJCC Cancer Staging Manual, 8th ed.

^c^Rules for Classification - The anatomical TNM system is a method for coding extent of disease. This is done by assigning a category of extent of disease for the tumor (T), regional lymph nodes (N), and distant metastases (M). T, N, and M are assigned by clinical means and by adding surgical findings and pathological information to the clinical information. The documented prognostic impact of postneoadjuvant extent of disease and response to therapy warrant clear definitions of the use of the yp prefix and response to therapy. The use of neoadjuvant therapy does not change the clinical (pretreatment) stage. As per TNM rules, the anatomical component of clinical stage is identified with the prefix c (e.g., cT). In addition, clinical staging can include the use of fine-needle aspiration (FNA) or core-needle biopsy and sentinel lymph node biopsy before neoadjuvant therapy. These are denoted with the postscripts f and sn, respectively. Nodal metastases confirmed by FNA or core-needle biopsy are classified as macrometastases (cN1), regardless of the size of the tumor focus in the final pathological specimen. For example, if, prior to neoadjuvant systemic therapy, a patient with a 1 cm primary has no palpable nodes but has an ultrasound-guided FNA biopsy of an axillary lymph node that is positive, the patient will be categorized as cN1 (f) for clinical (pretreatment) staging and is assigned to Stage IIA. Likewise, if the patient has a positive axillary sentinel node identified before neoadjuvant systemic therapy, the tumor is categorized as cN1 (sn) (Stage IIA). As per TNM rules, in the absence of pathological T evaluation (removal of the primary tumor), which is identified with prefix p (e.g., pT), microscopic evaluation of nodes before neoadjuvant therapy, even by complete removal such as sentinel node biopsy, is still classified as clinical (cN).

Table 3. Definition of Regional Lymph Nodes – Clinical (cN)^a,b^

cN Category | cN Criteria
cNX^c^ | Regional lymph nodes cannot be assessed (e.g., previously removed).
cN0 | No regional lymph node metastases (by imaging or clinical examination).
cN1 | Metastases to movable ipsilateral Level I, II axillary lymph nodes(s).
–cN1mi^d^ | Micrometastases (approximately 200 cells, >0.2 mm, but ≤2.0 mm).
cN2 | Metastases in ipsilateral Level I, II axillary lymph nodes that are clinically fixed or matted;
cN2 | or in ipsilateral internal mammary nodes in the absence of axillary lymph node metastases.
–cN2a | Metastases in ipsilateral Level I, II axillary lymph nodes fixed to one another (matted) or to other structures.
–cN2b | Metastases only in ipsilateral internal mammary nodes in the absence of axillary lymph node metastases.
cN3 | Metastases in ipsilateral infraclavicular (Level Ill axillary) lymph node(s) with or without Level l, II axillary lymph node involvement; or in ipsilateral internal mammary lymph node(s) with Level l, II axillary lymph node metastases; or metastases in ipsilateral supraclavicular lymph node(s) with or without axillary or internal mammary lymph node involvement.
–cN3a | Metastases in ipsilateral infraclavicular lymph node(s).
–cN3b | Metastases in ipsilateral internal mammary lymph node(s) and axillary lymph node(s).
–cN3c | Metastases in ipsilateral supraclavicular lymph node(s).

^a^Reprinted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

^b^(sn) and (f) suffixes should be added to the N category to denote confirmation of metastasis by sentinel node biopsy or fine-needle aspiration/core needle biopsy, respectively.

^c^The cNX category is used sparingly in cases where regional lymph nodes have previously been surgically removed or where there is no documentation of physical examination of the axilla.

^d^cN1mi is rarely used but may be appropriate in cases where sentinel node biopsy is performed before tumor resection, most likely to occur in cases treated with neoadjuvant therapy.

Table 4. Definition of Regional Lymph Nodes – Pathological (pN)^a,b^

pN Category | pN Criteria
pNX | Regional lymph nodes cannot be assessed (e.g., not removed for pathological study or previously removed).
pN0 | No regional lymph node metastasis identified or ITCs only.
–pN0(I+) | ITCs only (malignant cell clusters ≤0.2 mm) in regional lymph node(s).
–pN0(mol+) | Positive molecular findings by RT-PCR; no ITCs detected.
pN1 | Micrometastases; or metastases in 1–3 axillary lymph nodes; and/or clinically negative internal mammary nodes with micrometastases or macrometastases by sentinel lymph node biopsy.
–pN1mi | Micrometastases (~200 cells, >0.2 mm, but ≤2.0 mm).
–pN1a | Metastases in 1–3 axillary lymph nodes, at least one metastasis >2.0 mm.
–pN1b | Metastases in ipsilateral internal mammary sentinel nodes, excluding ITCs.
–pN1c | pN1a and pN1b combined.
pN2 | Metastases in 4–9 axillary lymph nodes; or positive ipsilateral internal mammary lymph nodes by imaging in the absence of axillary lymph node metastases.
–pN2a | Metastases in 4–9 axillary lymph nodes (at least 1 tumor deposit >2.0 mm).
–pN2b | Metastases in clinically detected internal mammary lymph nodes with or without microscopic confirmation; with pathologically negative axillary nodes.
pN3 | Metastases in ≥10 axillary lymph nodes; or in infraclavicular (Level Ill axillary) lymph nodes; or positive ipsilateral internal mammary lymph nodes by imaging in the presence of one or more positive Level l, II axillary lymph nodes; or in >3 axillary lymph nodes and micrometastases or macrometastases by sentinel lymph node biopsy in clinically negative ipsilateral internal mammary lymph nodes; or in ipsilateral supraclavicular lymph nodes.
–pN3a | Metastases in ≥10 axillary lymph nodes (at least 1 tumor deposit >2.0 mm); or metastases to the infraclavicular (Level III axillary lymph) nodes.
–pN3b | pN1a or pN2a in the presence of cN2b (positive internal mammary nodes by imaging);
–pN3b | or pN2a in the presence of pN1b.
–pN3c | Metastases in ipsilateral supraclavicular lymph nodes.

ITCs = isolated tumor cells; RT-PCR = reverse transcriptase-polymerase chain reaction.

^a^Reprinted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

^b^(sn) and (f) suffixes should be added to the N category to denote confirmation of metastasis by sentinel node biopsy or fine-needle aspiration/core needle biopsy, respectively, with NO further resection of nodes.

Table 5. Definition of Distant Metastasis (M)^a^

M Category | M Criteria
M0 | No clinical or radiographic evidence of distant metastases.^b^
cM0(I+) | No clinical or radiographic evidence of distant metastases in the presence of tumor cells or deposits ≤0.2 mm detected microscopically or by molecular techniques in circulating blood, bone marrow, or other nonregional nodal tissue in a patient without symptoms or signs of metastases.
cM1 | Distant metastases detected by clinical and radiographic means.
pM1 | Any histologically proven metastases in distant organs; or if in nonregional nodes, metastases >0.2 mm.

^a^Reprinted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

^b^Note that imaging studies are not required to assign the cM0 category.

Table 6. Definition of Histological Grade (G)^a^

G | G Definition
GX | Grade cannot be assessed.
G1 | Low combined histological grade (favorable), SBR score of 3–5 points.
G2 | Intermediate combined histological grade (moderately favorable); SBR score of 6–7 points.
G3 | High combined histological grade (unfavorable); SBR score of 8–9 points.

SBR = Scarff-Bloom-Richardson grading system, Nottingham Modification.

^a^Reprinted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

Table 7. Ductal Carcinoma in situ: Nuclear Grade^a^

G | G Definition
GX | Grade cannot be assessed.
G1 | Low nuclear grade.
G2 | Intermediate nuclear grade.
G3 | High nuclear grade.

^a^Reprinted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

### AJCC Anatomical and Prognostic Stage Groups

There are three stage group tables for invasive cancer:[3]

- Anatomical Stage Group. The Anatomical Stage Group table is used in regions of the world where tumor grading and/or biomarker testing for ER, PR, and HER2 are not routinely available. (See Table 8.)
- Clinical Prognostic Stage Group. The Clinical Prognostic Stage Group table is used for all patients in the United States. Patients who have neoadjuvant therapy as their initial treatment should have the clinical prognostic stage and the observed degree of response to treatment recorded, but these patients are not assigned a pathological prognostic stage. (See Table 9.)
- Pathological Prognostic Stage Group. The Pathological Prognostic Stage Group table is used for all patients in the United States who have surgery as initial treatment and have pathological T and N information reported. (See Table 10.)

In the United States, cancer registries and clinicians must use the Clinical and Pathological Prognostic Stage Group tables for reporting. It is expected that testing is performed for grade, HER2, ER, and PR status and that results are reported for all cases of invasive cancer in the United States.

AJCC Anatomical Stage Groups

Table 8. Definition of Anatomical Stage Groups^a^

Stage | TNM
0 | Tis, N0, M0
IA | T1, N0, M0
IB | T0, N1mi, M0
IB | T1, N1mi, M0
IIA | T0, N1, M0
IIA | T1, N1, M0
IIA | T2, N0, M0
IIB | T2, N1, M0
IIB | T3, N0, M0
IIIA | T0, N2, M0
IIIA | T1, N2, M0
IIIA | T2, N2, M0
IIIA | T3, N1, M0
IIIA | T3, N2, M0
IIIB | T4, N0, M0
IIIB | T4, N1, M0
IIIB | T4, N2, M0
IIIC | Any T (Tis, T1, T0, T2, T3, T4), N3, M0
IV | Any T (Tis, T1, T0, T2, T3, T4), Any N (N0, N1mi, N1, N2, N3), M1

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Adapted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

Notes:

1. T1 includes T1mi.

2. T0 and T1 tumors with nodal micrometastases (N1mi) are staged as Stage IB.

3. T2, T3, and T4 tumors with nodal micrometastases (N1mi) are staged using the N1 category.

4. M0 includes M0(I+).

5. The designation pM0 is not valid; any M0 is clinical.

6. If a patient presents with M1 disease before receiving neoadjuvant systemic therapy, the stage is Stage IV and remains Stage IV regardless of response to neoadjuvant therapy.

7. Stage designation may be changed if postsurgical imaging studies reveal the presence of distant metastases, provided the studies are performed within 4 months of diagnosis in the absence of disease progression, and provided the patient has not received neoadjuvant therapy.

8. Staging following neoadjuvant therapy is denoted with a yc or ypn prefix to the T and N classification. There is no anatomical stage group assigned if there is a complete pathological response (pCR) to neoadjuvant therapy, for example, ypT0, ypN0, cM0.

AJCC Prognostic Stage Groups

The Clinical Prognostic Stage is used for clinical classification and staging of patients in the United States with invasive breast cancer. It uses TNM information based on the patient’s history, physical examination, imaging results (not required for clinical staging), and biopsies.

Table 9. Definition of Clinical Prognostic Stage Groups^a^

TNM | Grade | HER2 Status | ER Status | PR Status | Stage Group
Tis, N0, M0 | Any (see Table 6 and Table 7) | Any | Any | Any | 0
T1^b^, N0, M0 | G1 | Positive | Positive | Positive | IA
T1^b^, N0, M0 | G1 | Positive | Positive | Negative | IA
T0, N1mi, M0 | G1 | Positive | Negative | Positive | IA
T0, N1mi, M0 | G1 | Positive | Negative | Negative | IA
T1^b^, N1mi, M0 | G1 | Negative | Positive | Positive | IA
T1^b^, N1mi, M0 | G1 | Negative | Positive | Negative | IA
T1^b^, N1mi, M0 | G1 | Negative | Negative | Positive | IA
T1^b^, N1mi, M0 | G1 | Negative | Negative | Negative | IB
T1^b^, N1mi, M0 | G2 | Positive | Positive | Positive | IA
T1^b^, N1mi, M0 | G2 | Positive | Positive | Negative | IA
T1^b^, N1mi, M0 | G2 | Positive | Negative | Positive | IA
T1^b^, N1mi, M0 | G2 | Positive | Negative | Negative | IA
T1^b^, N1mi, M0 | G2 | Negative | Positive | Positive | IA
T1^b^, N1mi, M0 | G2 | Negative | Positive | Negative | IA
T1^b^, N1mi, M0 | G2 | Negative | Negative | Positive | IA
T1^b^, N1mi, M0 | G2 | Negative | Negative | Negative | IB
T1^b^, N1mi, M0 | G3 | Positive | Positive | Positive | IA
T1^b^, N1mi, M0 | G3 | Positive | Positive | Negative | IA
T1^b^, N1mi, M0 | G3 | Positive | Negative | Positive | IA
T1^b^, N1mi, M0 | G3 | Positive | Negative | Negative | IA
T1^b^, N1mi, M0 | G3 | Negative | Positive | Positive | IA
T1^b^, N1mi, M0 | G3 | Negative | Positive | Negative | IB
T1^b^, N1mi, M0 | G3 | Negative | Negative | Positive | IB
T1^b^, N1mi, M0 | G3 | Negative | Negative | Negative | IB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Positive | Positive | IB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Positive | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Negative | Positive | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Negative | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Positive | Positive | IB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Positive | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Negative | Positive | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Negative | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Positive | Positive | IB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Positive | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Negative | Positive | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Negative | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Positive | Positive | IB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Positive | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Negative | Positive | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Negative | Negative | IIB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Positive | Positive | IB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Positive | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Negative | Positive | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Negative | Negative | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Positive | Positive | IIA
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Positive | Negative | IIB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Negative | Positive | IIB
T0, N1^c^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Negative | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G1 | Positive | Positive | Positive | IB
T2, N1^d^, M0; T3, N0, M0 | G1 | Positive | Positive | Negative | IIA
T2, N1^d^, M0; T3, N0, M0 | G1 | Positive | Negative | Positive | IIA
T2, N1^d^, M0; T3, N0, M0 | G1 | Positive | Negative | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G1 | Negative | Positive | Positive | IIA
T2, N1^d^, M0; T3, N0, M0 | G1 | Negative | Positive | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G1 | Negative | Negative | Positive | IIB
T2, N1^d^, M0; T3, N0, M0 | G1 | Negative | Negative | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G2 | Positive | Positive | Positive | IB
T2, N1^d^, M0; T3, N0, M0 | G2 | Positive | Positive | Negative | IIA
T2, N1^d^, M0; T3, N0, M0 | G2 | Positive | Negative | Positive | IIA
T2, N1^d^, M0; T3, N0, M0 | G2 | Positive | Negative | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G2 | Negative | Positive | Positive | IIA
T2, N1^d^, M0; T3, N0, M0 | G2 | Negative | Positive | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G2 | Negative | Negative | Positive | IIB
T2, N1^d^, M0; T3, N0, M0 | G2 | Negative | Negative | Negative | IIIB
T2, N1^d^, M0; T3, N0, M0 | G3 | Positive | Positive | Positive | IB
T2, N1^d^, M0; T3, N0, M0 | G3 | Positive | Positive | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G3 | Positive | Negative | Positive | IIB
T2, N1^d^, M0; T3, N0, M0 | G3 | Positive | Negative | Negative | IIB
T2, N1^d^, M0; T3, N0, M0 | G3 | Negative | Positive | Positive | IIB
T2, N1^d^, M0; T3, N0, M0 | G3 | Negative | Positive | Negative | IIIA
T2, N1^d^, M0; T3, N0, M0 | G3 | Negative | Negative | Positive | IIIA
T2, N1^d^, M0; T3, N0, M0 | G3 | Negative | Negative | Negative | IIIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Positive | Positive | IIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Positive | Positive | IIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Negative | Negative | IIIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Positive | Positive | IIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Positive | Positive | IIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Negative | Negative | IIIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Positive | Positive | IIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Positive | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Positive | Negative | IIIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Negative | Positive | IIIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0; T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Negative | Negative | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Positive | Positive | IIIA
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Negative | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Positive | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Negative | Negative | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Positive | Positive | IIIA
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Negative | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Positive | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Negative | Negative | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Positive | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Negative | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Positive | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Positive | Negative | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Negative | Positive | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Negative | Negative | IIIC
Any T, Any N, M1 | Any (see Table 6 and Table 7) | Any | Any | Any | IV

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Adapted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

^b^T1 includes T1mi.

^c^N1 does not include N1mi. T1, N1mi, M0, and T0, N1mi, M0 cancers are included for prognostic staging with T1, N0, M0 cancers of the same prognostic factor status.

^d^N1 includes N1mi. T2, T3, and T4 cancers and N1mi are included for prognostic staging with T2, N1; T3, N1; and T4, N1, respectively.

Notes:

1. Because N1mi categorization requires evaluation of the entire node, and cannot be assigned on the basis of a fine-needle aspiration or core biopsy, N1mi can only be used with Clinical Prognostic Staging when clinical staging is based on a resected lymph node in the absence of resection of the primary cancer, such as in the situation where sentinel node biopsy is performed before receiving neoadjuvant chemotherapy or endocrine therapy.

2. For cases with lymph node involvement with no evidence of primary tumor (e.g., T0, N1, etc.) or with breast ductal carcinoma in situ (e.g.,Tis, N1, etc.), the grade, human epidermal growth factor receptor 2 (HER2), estrogen receptor, and progesterone receptor information from the tumor in the lymph node should be used for assigning stage group.

3. For cases where HER2 is determined to be equivocal by in situ hybridization (fluorescence in situ hybridization or chromogenic in situ hybridization) testing under the 2013 American Society of Clinical Oncologists/College of American Pathologists HER2 testing guidelines, the HER2-negative category should be used for staging in the Pathological Prognostic Stage Group table.[4,5]

4. The prognostic value of these Prognostic Stage Groups is based on populations of persons with breast cancer that have been offered and mostly treated with appropriate endocrine and/or systemic chemotherapy (including anti–HER2 therapy).

### AJCC Pathological Prognostic Stage Groups

The Pathological Prognostic Stage applies to patients with invasive breast cancer initially treated with surgery. It includes all information used for clinical staging, surgical findings, and pathological findings following surgery to remove the tumor. Pathological Prognostic Stage is not used for patients treated with neoadjuvant therapy before surgery to remove the tumor.[3]

Table 10. Definition of Pathological Prognostic Stage Groups^a^

TNM | Grade | HER2 Status | ER Status | PR Status | Stage Group
Tis, N0, M0 | Any (see Table 6 and Table 7) | Any | Any | Any | 0
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Positive | Positive | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Positive | Positive | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Positive | Negative | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Positive | Negative | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Negative | Positive | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Negative | Positive | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Negative | Negative | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G1 | Negative | Negative | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Positive | Positive | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Positive | Positive | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Positive | Negative | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Positive | Negative | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Negative | Positive | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Negative | Positive | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Negative | Negative | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G2 | Negative | Negative | Negative | IB
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Positive | Positive | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Positive | Positive | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Positive | Negative | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Positive | Negative | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Negative | Positive | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Negative | Positive | Negative | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Negative | Negative | Positive | IA
T1^b^, N0, M0; T0, N1mi, M0; T1^b^, N1mi, M0 | G3 | Negative | Negative | Negative | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Positive | Positive | IA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Positive | Negative | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Negative | Positive | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Positive | Negative | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Positive | Positive | IA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Positive | Negative | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Negative | Positive | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G1 | Negative | Negative | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Positive | Positive | IA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Positive | Negative | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Negative | Positive | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Positive | Negative | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Positive | Positive | IA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Positive | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Negative | Positive | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G2 | Negative | Negative | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Positive | Positive | IA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Positive | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Negative | Positive | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Positive | Negative | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Positive | Positive | IB
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Positive | Negative | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Negative | Positive | IIA
T0, N1^c ^, M0; T1^b^, N1^c^, M0; T2, N0, M0 | G3 | Negative | Negative | Negative | IIA
T2, N1^c^, M0; T3, N0, M0 | G1 | Positive | Positive | Positive | IA
T2, N1^c^, M0; T3, N0, M0 | G1 | Positive | Positive | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G1 | Positive | Negative | Positive | IIB
T2, N1^c^, M0; T3, N0, M0 | G1 | Positive | Negative | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G1 | Negative | Positive | Positive | IA
T2, N1^c^, M0; T3, N0, M0 | G1 | Negative | Positive | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G1 | Negative | Negative | Positive | IIB
T2, N1^c^, M0; T3, N0, M0 | G1 | Negative | Negative | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G2 | Positive | Positive | Positive | IB
T2, N1^c^, M0; T3, N0, M0 | G2 | Positive | Positive | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G2 | Positive | Negative | Positive | IIB
T2, N1^c^, M0; T3, N0, M0 | G2 | Positive | Negative | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G2 | Negative | Positive | Positive | IB
T2, N1^c^, M0; T3, N0, M0 | G2 | Negative | Positive | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G2 | Negative | Negative | Positive | IIB
T2, N1^c^, M0; T3, N0, M0 | G2 | Negative | Negative | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G3 | Positive | Positive | Positive | IB
T2, N1^c^, M0; T3, N0, M0 | G3 | Positive | Positive | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G3 | Positive | Negative | Positive | IIB
T2, N1^c^, M0; T3, N0, M0 | G3 | Positive | Negative | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G3 | Negative | Positive | Positive | IIA
T2, N1^c^, M0; T3, N0, M0 | G3 | Negative | Positive | Negative | IIB
T2, N1^c^, M0; T3, N0, M0 | G3 | Negative | Negative | Positive | IIB
T2, N1^c^, M0; T3, N0, M0 | G3 | Negative | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Positive | Positive | IB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Positive | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Positive | Positive | IB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G1 | Negative | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Positive | Positive | IB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Positive | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Positive | Positive | IB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G2 | Negative | Negative | Negative | IIIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Positive | Positive | IIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Positive | Negative | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Positive | Positive | IIB
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Positive | Negative | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Negative | Positive | IIIA
T0, N2, M0; T1^b^, N2, M0; T2, N2, M0, T3, N1^d^, M0; T3, N2, M0 | G3 | Negative | Negative | Negative | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Positive | Positive | IIIA
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Positive | Negative | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Positive | Positive | IIIA
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G1 | Negative | Negative | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Positive | Positive | IIIA
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Positive | Negative | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Positive | Positive | IIIA
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G2 | Negative | Negative | Negative | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Positive | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Positive | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Negative | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Positive | Negative | Negative | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Positive | Positive | IIIB
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Positive | Negative | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Negative | Positive | IIIC
T4, N0, M0; T4, N1^d^, M0; T4, N2, M0; Any T, N3, M0 | G3 | Negative | Negative | Negative | IIIC
Any T, Any N, M1 | Any (see Table 6 and Table 7) | Any | Any | Any | IV

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Adapted with permission from AJCC: Breast, revised version. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 4–96.

^b^T1 includes T1mi.

^c^N1 does not include N1mi. T1, N1mi, M0 and T0, N1mi, M0 cancers are included for prognostic staging with T1, N0, M0 cancers of the same prognostic factor status.

^d^N1 includes N1mi. T2, T3, and T4 cancers and N1mi are included for prognostic staging with T2, N1; T3, N1; and T4, N1, respectively.

Notes:

1. For cases with lymph node involvement with no evidence of primary tumor (e.g., T0, N1, etc.) or with breast ductal carcinoma in situ (e.g.,Tis, N1, etc.), the grade, human epidermal growth factor receptor 2 (HER2), estrogen receptor, and progesterone receptor information from the tumor in the lymph node should be used for assigning stage group.

2. For cases where HER2 is determined to be equivocal by in situ hybridization (fluorescence in situ hybridization or chromogenic in situ hybridization) testing under the 2013 American Society of Clinical Oncologists/College of American Pathologists HER2 testing guidelines, the HER2-negative category should be used for staging in the Pathological Prognostic Stage Group table.[4,5]

3. The prognostic value of these Prognostic Stage Groups is based on populations of persons with breast cancer that have been offered and mostly treated with appropriate endocrine and/or systemic chemotherapy (including anti–HER2 therapy).

### References

Barnes DM, Harris WH, Smith P, et al.: Immunohistochemical determination of oestrogen receptor: comparison of different methods of assessment of staining and correlation with clinical outcome of breast cancer patients. Br J Cancer 74 (9): 1445-51, 1996.8912543
Wolff AC, Somerfield MR, Dowsett M, et al.: Human Epidermal Growth Factor Receptor 2 Testing in Breast Cancer: ASCO-College of American Pathologists Guideline Update. J Clin Oncol 41 (22): 3867-3872, 2023.37284804
Breast. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 589–628.
Wolff AC, Hammond ME, Hicks DG, et al.: Recommendations for human epidermal growth factor receptor 2 testing in breast cancer: American Society of Clinical Oncology/College of American Pathologists clinical practice guideline update. J Clin Oncol 31 (31): 3997-4013, 2013.24101045
Wolff AC, Hammond ME, Hicks DG, et al.: Recommendations for human epidermal growth factor receptor 2 testing in breast cancer: American Society of Clinical Oncology/College of American Pathologists clinical practice guideline update. Arch Pathol Lab Med 138 (2): 241-56, 2014.24099077

## Surgical Treatment for Breast Cancer

Operable breast cancer requires a multimodal approach to treatment. After the presence of a malignancy is confirmed by biopsy, the following surgical treatment options can be discussed with the patient before a therapeutic procedure is selected:

- Breast-conserving surgery.
- Modified radical mastectomy (removal of the entire breast with axillary dissection of levels I and II) with or without breast reconstruction.

To guide the selection of neoadjuvant or adjuvant therapy, many factors including stage, grade, and molecular status of the tumor (e.g., estrogen receptor [ER], progesterone receptor [PR], human epidermal growth factor type 2 receptor [HER2], or triple-negative status) are considered.[1-5]

### Surgical Staging of the Primary Tumor

Selection of a local therapeutic approach depends on the following factors:[6]

- Location and size of the lesion.
- Analysis of the mammogram and/or magnetic resonance imaging or additional imaging.
- Breast size.
- Patient’s desire to preserve the breast.

Options for surgical management of the primary tumor include:

- Breast-conserving surgery (with consideration of radiation therapy). All histological types of invasive breast cancer may be treated with breast-conserving surgery plus radiation therapy.[7] However, the presence of inflammatory breast cancer, regardless of histological subtype, is a contraindication to breast-conserving therapy. The presence of multifocal disease in the breast and a history of collagen vascular disease are relative contraindications to breast-conserving therapy. Prior radiation to the breast was previously considered a contraindication to breast-conserving surgery. However, research has increasingly shown that repeat radiation therapy may be feasible and safe in select patient populations.[8]
- Mastectomy with or without breast reconstruction.

Survival is equivalent with any of these options, as documented in the EORTC-10801 trial [9] and other prospective randomized trials.[10-16] Also, a retrospective study of 753 patients who were divided into three groups based on hormone receptor status (ER positive or PR positive; ER negative and PR negative but HER2 positive; and triple negative) found no differences in disease control within the breast in patients treated with standard breast-conserving surgery; however, there are not yet substantive data to support this finding.[17]

The rate of local recurrence in the breast after conservative treatment is low and varies slightly with the surgical technique used (e.g., lumpectomy, quadrantectomy, segmental mastectomy, and others). Whether completely clear microscopic margins are necessary has been debated.[18-20] However, a multidisciplinary consensus panel recently used margin width and ipsilateral breast tumor recurrence from a meta-analysis of 33 studies (N = 28,162 patients) as the primary evidence base for a new consensus regarding margins in patients with stage I and stage II breast cancer treated with breast-conserving surgery plus radiation therapy. Results of the meta-analysis include the following:[21]

- Positive margins (ink on invasive carcinoma or ductal carcinoma in situ) were associated with a twofold increase in the risk of ipsilateral breast tumor recurrence compared with negative margins.
- More widely clear margins were not found to significantly decrease the rate of ipsilateral breast tumor recurrence compared with no ink on tumor. Thus, it was recommended that the use of no ink on tumor be the new standard for an adequate margin in invasive cancer.
- There was no evidence that more widely clear margins reduced ipsilateral breast tumor recurrence for young patients or for those with unfavorable biology, lobular cancers, or cancers with an extensive intraductal component.

For patients undergoing partial mastectomy, margins may be positive after primary surgery, often leading to re-excision. A clinical trial of 235 patients with stage 0 to III breast cancer who underwent partial mastectomy, with or without resection of selective margins, randomly assigned patients to have additional cavity shave margins resected (shave group) or not (no-shave group).[22] Patients in the shave group had a significantly lower rate of positive margins than those in the no-shave group (19% vs. 34%, P = .01) and a lower rate of second surgery for clearing margins (10% vs. 21%, P = .02).[22][Level of evidence B3]

### Axillary Lymph Node Management

Axillary node status remains the most important predictor of outcome in patients with breast cancer. The axillary lymph nodes are staged to aid in determining prognosis and therapy.

Sentinel lymph node (SLN) biopsy is the initial standard axillary staging procedure performed in women with invasive breast cancer. The SLN is defined as any node that receives drainage directly from the primary tumor, allowing for more than one SLN, which is often the case. Studies have shown that the injection of technetium Tc 99m-labeled sulfur colloid, vital blue dye, or both around the tumor or biopsy cavity, or in the subareolar area, and subsequent drainage of these compounds to the axilla results in the identification of the SLN in 92% to 98% of patients.[23,24] These reports demonstrate a 97.5% to 100% concordance between SLN biopsy and complete axillary lymph node dissection (ALND). SLN biopsy alone is associated with less morbidity than axillary lymphadenectomy.[25-28]

Evidence (SLN biopsy):

1. ALMANAC, a randomized trial of 1,031 women compared SLN biopsy followed by ALND when the SLN was positive with ALND in all patients.[29][Level of evidence A3]
  - Quality of life at 1 year (as assessed by the frequency of patients experiencing a clinically significant deterioration in the Trial Outcome Index of the Functional Assessment of Cancer Therapy-Breast scale) was superior in the SLN biopsy group (23% deteriorating in the SLN biopsy group vs. 35% in the ALND group; P = .001). Arm function was also better in the SLN group.
2. The National Surgical Adjuvant Breast and Bowel Project’s (NSABP-B-32 (https://www.cancer.gov/clinicaltrials/NCT00003830) [NCT00003830]) multicenter, phase III trial randomly assigned women (N = 5,611) to undergo either SLN plus ALND or SLN resection alone. ALND was only performed if the SLNs were positive.[30][Level of evidence A1]
  - The study showed no detectable difference in overall survival (OS), disease-free survival (DFS), and regional control. The OS rate was 91.8% for SLN plus ALND versus 90.3% for SLN resection alone (P = .12).

Because of the following trial results, ALND is unnecessary after a positive SLN biopsy in patients with limited SLN-positive breast cancer treated with breast conservation or mastectomy, radiation therapy, and systemic therapy.

Evidence (ALND after a positive SLN biopsy in patients with limited SLN-positive breast cancer):

1. ACOSOG Z0011 (https://www.cancer.gov/clinicaltrials/NCT00003855) (Alliance, NCT00003855), a phase III, noninferiority, multicenter, randomized clinical trial, evaluated whether ALND is required after a positive SLN biopsy. Women were randomly assigned to undergo ALND or no further axillary treatment. Patients had clinical T1 or T2 invasive breast cancer without palpable adenopathy and one to two SLNs containing metastases identified by frozen section. All patients underwent lumpectomy, tangential whole-breast radiation therapy, and appropriate systemic therapy. OS was the primary end point, and DFS was the secondary end point. Because of enrollment challenges, a total of 891 women out of a target enrollment of 1,900 women were randomly assigned to one of the two treatment arms.[Level of evidence A1]
  - At a median follow-up of 6.3 years, the 5-year OS rate was 91.8% (95% confidence interval [CI], 89.1%–94.5%) with ALND and 92.5% (95% CI, 90.0%–95.1%) with SLN biopsy alone.
  - Detailed analysis of the radiation field design found that 15% of patients also received treatment to the supraclavicular region (in addition to standard tangents). Of those with detailed radiation records available for review, 43 patients (18.9%) received regional nodal radiation therapy.[31]
  - The 5-year DFS rate was 82.2% (95% CI, 78.3%–86.3%) with ALND and 83.9% (95% CI, 80.2%–87.9%) with SLN biopsy alone.
2. In a similarly designed trial (IBCSG 23-01), 929 women with breast tumors smaller than 5 cm and SLN involvement smaller than 2 mm were randomly assigned to ALND or no ALND.[32][Level of evidence A1]
  - Patients without axillary dissection had fewer DFS events (hazard ratio [HR], 0.78; 95% CI, 0.55–1.11).
  - No difference in OS was observed.
3. The AMAROS (https://www.cancer.gov/clinicaltrials/NCT00014612) trial (NCT00014612) studied ALND and axillary radiation therapy after identification of a positive SLN.[33][Level of evidence A1]
  - ALND and axillary radiation therapy provided excellent and comparable axillary control for patients with T1 or T2 primary breast cancer and no palpable lymphadenopathy who underwent breast-conserving therapy or mastectomy.
  - The use of axillary radiation therapy was also associated with significantly less morbidity.

For patients who require an ALND, the standard evaluation usually involves only a level I and II dissection, thereby removing a satisfactory number of nodes for evaluation (i.e., at least 6–10), while reducing morbidity from the procedure.

Although SLN biopsy has been the standard for the axillary staging of patients with invasive breast cancer and a clinically negative axilla, two randomized controlled trials have identified populations for which SLN biopsy could be omitted.

Evidence (omission of SLN biopsy):

1. The SOUND (https://www.cancer.gov/clinicaltrials/NCT02167490) trial (NCT02167490), a multicenter, noninferiority, randomized clinical trial, evaluated omitting SLN biopsy in women with invasive breast cancer. Patients were of any age, had tumors smaller than 2 cm, had negative preoperative axillary ultrasonography, and planned to receive breast-conserving surgery and adjuvant radiation therapy. A total of 1,493 women were randomly assigned to undergo SLN biopsy or no axillary surgery. The median follow-up was 5.7 years.[34][Level of evidence A1]
  - The 5-year distant DFS rate was 97.7% in the SLN biopsy group and 98.0% in the no-surgery group (log-rank P = .67; HR, 0.84; 90% CI, 0.45–1.54; noninferiority P = .02).
  - A total of 12 locoregional relapses (1.7%), 13 distant metastases (1.8%), and 21 deaths (3.0%) were observed in the SLN biopsy group, compared with 11 locoregional relapses (1.6%), 14 distant metastases (2.0%), and 18 deaths (2.6%) in the no-surgery group.
2. The multicenter, noninferiority, randomized INSEMA (https://www.cancer.gov/clinicaltrials/NCT02466737) trial (NCT02466737) evaluated omitting SLN biopsy in 5,502 women with clinically node-negative invasive breast cancer. Tumors had to be smaller than 5 cm, and most patients had T1 disease and ER-positive tumors. Patients were scheduled to undergo breast-conserving surgery and whole-breast radiation therapy. Patients were randomly assigned in a 1:4 ratio to undergo no axillary surgery or SLN biopsy. The median follow-up was 6 years.[35][Level of evidence A1]
  - The 5-year invasive DFS rate was 91.9% in the no-surgery group and 91.7% in the SLN biopsy group (HR, 0.91; 95% CI, 0.73–1.14), which was below the prespecified noninferiority margin.
  - Patients in the no-surgery group had a lower incidence of lymphedema, greater arm mobility, and less pain with movement of the arm or shoulder than patients who underwent SLN biopsy.

### Breast Reconstruction

For patients who opt for a total mastectomy, reconstructive surgery may be performed at the time of the mastectomy (immediate reconstruction) or at some subsequent time (delayed reconstruction).[36-39] Breast contour can be restored by the following procedures:

- Mastopexy.
- Submuscular insertion of an artificial implant (silicone or saline filled). If an immediate implant cannot technically be performed, a tissue expander can be inserted beneath the pectoral muscle. Saline is injected into the expander to stretch the tissues for a period of weeks or months until the desired volume is obtained. The tissue expander is then replaced by a permanent implant. For more information on breast implants, see the U.S. Food and Drug Administration (https://www.fda.gov/medical-devices/implants-and-prosthetics/breast-implants).
- Rectus muscle or other flap. Muscle flaps require a considerably more complicated and prolonged operative procedure, and blood transfusions may be required.

After breast reconstruction, radiation therapy can be delivered to the chest wall and regional nodes if indicated in either the adjuvant or local recurrent disease setting. Radiation therapy after reconstruction with either a breast prosthesis or a tissue flap may affect cosmesis and symmetry. The incidence of capsular fibrosis, pain, or the need for implant removal may also be increased.[40]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Fisher B, Fisher ER, Redmond C, et al.: Tumor nuclear grade, estrogen receptor, and progesterone receptor: their value alone or in combination as indicators of outcome following adjuvant therapy for breast cancer. Breast Cancer Res Treat 7 (3): 147-60, 1986.3535933 87050082
Thor AD, Berry DA, Budman DR, et al.: erbB-2, p53, and efficacy of adjuvant therapy in lymph node-positive breast cancer. J Natl Cancer Inst 90 (18): 1346-60, 1998.9747866 98418638
Paik S, Bryant J, Park C, et al.: erbB-2 and response to doxorubicin in patients with axillary lymph node-positive, hormone receptor-negative breast cancer. J Natl Cancer Inst 90 (18): 1361-70, 1998.9747867 98418639
Simpson JF, Gray R, Dressler LG, et al.: Prognostic value of histologic grade and proliferative activity in axillary node-positive breast cancer: results from the Eastern Cooperative Oncology Group Companion Study, EST 4189. J Clin Oncol 18 (10): 2059-69, 2000.10811671 20271995
Hutchins LF, Green SJ, Ravdin PM, et al.: Randomized, controlled trial of cyclophosphamide, methotrexate, and fluorouracil versus cyclophosphamide, doxorubicin, and fluorouracil with and without tamoxifen for high-risk, node-negative breast cancer: treatment results of Intergroup Protocol INT-0102. J Clin Oncol 23 (33): 8313-21, 2005.16293862
Abrams JS, Phillips PH, Friedman MA: Meeting highlights: a reappraisal of research results for the local treatment of early stage breast cancer. J Natl Cancer Inst 87 (24): 1837-45, 1995.7494227 96101745
Weiss MC, Fowble BL, Solin LJ, et al.: Outcome of conservative therapy for invasive breast cancer by histologic subtype. Int J Radiat Oncol Biol Phys 23 (5): 941-7, 1992.1322387 92348229
Arthur DW, Winter KA, Kuerer HM, et al.: Effectiveness of Breast-Conserving Surgery and 3-Dimensional Conformal Partial Breast Reirradiation for Recurrence of Breast Cancer in the Ipsilateral Breast: The NRG Oncology/RTOG 1014 Phase 2 Clinical Trial. JAMA Oncol 6 (1): 75-82, 2020.31750868
van Dongen JA, Voogd AC, Fentiman IS, et al.: Long-term results of a randomized trial comparing breast-conserving therapy with mastectomy: European Organization for Research and Treatment of Cancer 10801 trial. J Natl Cancer Inst 92 (14): 1143-50, 2000.10904087 20366263
Fisher B, Anderson S, Bryant J, et al.: Twenty-year follow-up of a randomized trial comparing total mastectomy, lumpectomy, and lumpectomy plus irradiation for the treatment of invasive breast cancer. N Engl J Med 347 (16): 1233-41, 2002.12393820 22282026
Blichert-Toft M, Rose C, Andersen JA, et al.: Danish randomized trial comparing breast conservation therapy with mastectomy: six years of life-table analysis. Danish Breast Cancer Cooperative Group. J Natl Cancer Inst Monogr (11): 19-25, 1992.1627427 92329265
van Dongen JA, Bartelink H, Fentiman IS, et al.: Randomized clinical trial to assess the value of breast-conserving therapy in stage I and II breast cancer, EORTC 10801 trial. J Natl Cancer Inst Monogr (11): 15-8, 1992.1627421 92329258
Sarrazin D, Lê MG, Arriagada R, et al.: Ten-year results of a randomized trial comparing a conservative treatment to mastectomy in early breast cancer. Radiother Oncol 14 (3): 177-84, 1989.2652199 89221648
Jacobson JA, Danforth DN, Cowan KH, et al.: Ten-year results of a comparison of conservation with mastectomy in the treatment of stage I and II breast cancer. N Engl J Med 332 (14): 907-11, 1995.7877647 95183091
Veronesi U, Cascinelli N, Mariani L, et al.: Twenty-year follow-up of a randomized study comparing breast-conserving surgery with radical mastectomy for early breast cancer. N Engl J Med 347 (16): 1227-32, 2002.12393819 22282025
Veronesi U, Salvadori B, Luini A, et al.: Breast conservation is a safe method in patients with small cancer of the breast. Long-term results of three randomised trials on 1,973 patients. Eur J Cancer 31A (10): 1574-9, 1995.7488404 96096167
Freedman GM, Anderson PR, Li T, et al.: Locoregional recurrence of triple-negative breast cancer after breast-conserving surgery and radiation. Cancer 115 (5): 946-51, 2009.19156929
Schmidt-Ullrich R, Wazer DE, Tercilla O, et al.: Tumor margin assessment as a guide to optimal conservation surgery and irradiation in early stage breast carcinoma. Int J Radiat Oncol Biol Phys 17 (4): 733-8, 1989.2777663 89379925
Solin LJ, Fowble BL, Schultz DJ, et al.: The significance of the pathology margins of the tumor excision on the outcome of patients treated with definitive irradiation for early stage breast cancer. Int J Radiat Oncol Biol Phys 21 (2): 279-87, 1991.1648041 91285926
Wazer DE, Schmidt-Ullrich RK, Schmid CH, et al.: The value of breast lumpectomy margin assessment as a predictor of residual tumor burden. Int J Radiat Oncol Biol Phys 38 (2): 291-9, 1997.9226315 97369874
Moran MS, Schnitt SJ, Giuliano AE, et al.: Society of Surgical Oncology-American Society for Radiation Oncology consensus guideline on margins for breast-conserving surgery with whole-breast irradiation in stages I and II invasive breast cancer. J Clin Oncol 32 (14): 1507-15, 2014.24516019
Chagpar AB, Killelea BK, Tsangaris TN, et al.: A Randomized, Controlled Trial of Cavity Shave Margins in Breast Cancer. N Engl J Med 373 (6): 503-10, 2015.26028131
Kern KA: Sentinel lymph node mapping in breast cancer using subareolar injection of blue dye. J Am Coll Surg 189 (6): 539-45, 1999.10589589 20055506
Rubio IT, Korourian S, Cowan C, et al.: Sentinel lymph node biopsy for staging breast cancer. Am J Surg 176 (6): 532-7, 1998.9926785 99123975
Veronesi U, Paganelli G, Galimberti V, et al.: Sentinel-node biopsy to avoid axillary dissection in breast cancer with clinically negative lymph-nodes. Lancet 349 (9069): 1864-7, 1997.9217757 97360794
Albertini JJ, Lyman GH, Cox C, et al.: Lymphatic mapping and sentinel node biopsy in the patient with breast cancer. JAMA 276 (22): 1818-22, 1996.8946902 97102662
Krag D, Weaver D, Ashikaga T, et al.: The sentinel node in breast cancer--a multicenter validation study. N Engl J Med 339 (14): 941-6, 1998.9753708 98418644
Veronesi U, Paganelli G, Viale G, et al.: Sentinel lymph node biopsy and axillary dissection in breast cancer: results in a large series. J Natl Cancer Inst 91 (4): 368-73, 1999.10050871 99158158
Mansel RE, Fallowfield L, Kissin M, et al.: Randomized multicenter trial of sentinel node biopsy versus standard axillary treatment in operable breast cancer: the ALMANAC Trial. J Natl Cancer Inst 98 (9): 599-609, 2006.16670385
Krag DN, Anderson SJ, Julian TB, et al.: Sentinel-lymph-node resection compared with conventional axillary-lymph-node dissection in clinically node-negative patients with breast cancer: overall survival findings from the NSABP B-32 randomised phase 3 trial. Lancet Oncol 11 (10): 927-33, 2010.20863759
Jagsi R, Chadha M, Moni J, et al.: Radiation field design in the ACOSOG Z0011 (Alliance) Trial. J Clin Oncol 32 (32): 3600-6, 2014.25135994
Galimberti V, Cole BF, Zurrida S, et al.: Axillary dissection versus no axillary dissection in patients with sentinel-node micrometastases (IBCSG 23-01): a phase 3 randomised controlled trial. Lancet Oncol 14 (4): 297-305, 2013.23491275
Donker M, van Tienhoven G, Straver ME, et al.: Radiotherapy or surgery of the axilla after a positive sentinel node in breast cancer (EORTC 10981-22023 AMAROS): a randomised, multicentre, open-label, phase 3 non-inferiority trial. Lancet Oncol 15 (12): 1303-10, 2014.25439688
Gentilini OD, Botteri E, Sangalli C, et al.: Sentinel Lymph Node Biopsy vs No Axillary Surgery in Patients With Small Breast Cancer and Negative Results on Ultrasonography of Axillary Lymph Nodes: The SOUND Randomized Clinical Trial. JAMA Oncol 9 (11): 1557-1564, 2023.37733364
Reimer T, Stachs A, Veselinovic K, et al.: Axillary Surgery in Breast Cancer - Primary Results of the INSEMA Trial. N Engl J Med 392 (11): 1051-1064, 2025.39665649
Cunningham BL: Breast reconstruction following mastectomy. In: Najarian JS, Delaney JP, eds.: Advances in Breast and Endocrine Surgery. Year Book Medical Publishers, 1986, pp 213-226.
Scanlon EF: The role of reconstruction in breast cancer. Cancer 68 (5 Suppl): 1144-7, 1991.1913496 92005234
Hang-Fu L, Snyderman RK: State-of-the-art breast reconstruction. Cancer 68 (5 Suppl): 1148-56, 1991.1913497 92005235
Feller WF, Holt R, Spear S, et al.: Modified radical mastectomy with immediate breast reconstruction. Am Surg 52 (3): 129-33, 1986.3006563 86157151
Kuske RR, Schuster R, Klein E, et al.: Radiotherapy and breast reconstruction: clinical results and dosimetry. Int J Radiat Oncol Biol Phys 21 (2): 339-46, 1991.2061110 91285934

## Radiation Therapy for Breast Cancer

Radiation therapy is standard after breast-conserving surgery as part of breast-conserving therapy. Radiation therapy is also considered for high-risk postmastectomy patients. The main goal of adjuvant radiation therapy is to eradicate residual disease, reducing local recurrence and increasing breast cancer–specific survival.[1]

### Post–Breast-Conserving Surgery

For women who have breast-conserving surgery without radiation therapy, the risk of recurrence in the conserved breast is substantial (>20%) even in women with confirmed axillary lymph node–negative disease.[2] Although all trials assessing the role of radiation therapy in breast-conserving therapy have shown highly statistically significant reductions in local recurrence rate, no single trial has demonstrated a statistically significant reduction in mortality. However, a large meta-analysis demonstrated a significant reduction in risk of recurrence and breast cancer death.[3] Overall, evidence supports the use of whole-breast radiation therapy after breast-conserving surgery.

Evidence (breast-conserving surgery followed by radiation therapy):

1. A 2011 meta-analysis of 17 clinical trials performed by the Early Breast Cancer Trialists’ Collaborative Group (EBCTCG), which included over 10,000 women with early-stage breast cancer, supported whole-breast radiation therapy after breast-conserving surgery.[3][Level of evidence A1]
  - Whole-breast radiation therapy resulted in a significant reduction in the 10-year risk of recurrence compared with breast-conserving surgery alone (19% for whole-breast radiation therapy vs. 35% for breast-conserving surgery alone; relative risk [RR], 0.52; 95% confidence interval [CI], 0.48–0.56) and a significant reduction in the 15-year risk of breast cancer death (21% for whole-breast radiation therapy vs. 25% for breast-conserving surgery alone; RR, 0.82; 95% CI, 0.75–0.90).

Regarding radiation dosing and schedule, the following has been noted:

- Whole-breast radiation dose. Conventional whole-breast radiation therapy is delivered to the whole breast (with or without regional lymph nodes) in 1.8 Gy to 2 Gy daily fractions over 5 to 6.5 weeks to a total dose of 45 Gy to 50 Gy.
- Radiation boost. A further radiation boost is commonly given to the tumor bed. Two randomized trials conducted in Europe have shown that boosts of 10 Gy to 16 Gy reduce the risk of local recurrence from 4.6% to 3.6% at 3 years (P = .044),[4][Level of evidence B1] and from 7.3% to 4.3% at 5 years (P < .001).[5][Level of evidence B1] Results were similar after a median follow-up of 17.2 years.[6][Level of evidence B1] If a boost is used, it can be delivered either by external-beam radiation therapy, generally with electrons, or by using an interstitial radioactive implant.[7] Administering a radiation boost may, however, be associated with unfavorable quality-of-life outcomes.[8]
- Radiation schedule. Some studies show that a shorter fractionation schedule of 42.5 Gy over 3 to 4 weeks is a reasonable alternative for some patients with breast cancer.
  - A noninferiority trial of 1,234 randomly assigned patients with node-negative invasive breast cancer analyzed locoregional recurrence rates with conventional whole-breast radiation therapy versus a shorter fractionation schedule.[9] The 10-year locoregional relapse rate among women who received shorter fractionation was not inferior to conventional whole-breast radiation therapy (6.2% for a shorter fractionation schedule vs. 6.7% for whole-breast radiation therapy with absolute difference, 0.5 percentage points; 95% CI, −2.5 to 3.5).[9][Level of evidence B1
  - Similarly, a combined analysis of the randomized United Kingdom Standardisation of Breast Radiotherapy trials (START), (START-A [ISRCTN59368779]) and START-B [ISRCTN59368779]) revealed no difference in a 10-year locoregional relapse rate. These trials collectively randomly assigned 4,451 women with completely excised invasive (pT1–3a, pN0–1, M0) early-stage breast cancer after breast-conserving surgery to receive conventional whole-breast radiation therapy dosing or shorter fractionation.[10][Level of evidence B1]
  - A meta-analysis that included the three trials mentioned above plus six others confirmed that differences with respect to local recurrence or cosmesis between shorter and conventional fractionation schedules were neither statistically nor clinically significant.[11]

Additional studies are needed to determine whether shorter fractionation is appropriate for women with higher nodal disease burden.[10]

#### Omission of radiation therapy for favorable, early-stage breast cancer

The omission of radiation therapy after breast-conserving surgery has been tested in older patients with early-stage (T1 and small T2), hormone receptor–positive tumors after primary surgery. Two large trials found that radiation can be safely omitted without survival deficit, but with an increased risk of local recurrence of about 8% at 10 years, assuming that hormonal therapy is used.

1. CALGB 9343 was a phase III randomized trial of radiation omission. A total of 636 women were enrolled; 317 women received tamoxifen plus radiation therapy, and 319 women received tamoxifen alone. Eligible women were aged 70 years or older and had clinical stage I estrogen receptor (ER)-positive breast cancer. Initial eligibility criteria included breast cancers measuring up to 4 cm regardless of ER status, but in August 1996 this was reduced to measuring up to 2 cm (T1) with ER-positive or indeterminate receptor status. Patients were required to have clinically negative axillae.[12][Level of evidence A1]
  - At 10 years, 98% of patients in the tamoxifen-plus-radiation group (95% CI, 96%–99%) were free from local and regional recurrences compared with 90% in the tamoxifen-alone group (95% CI, 85%–93%).
  - There were no significant differences in time-to-mastectomy, time-to-distant metastasis, breast cancer–specific survival, or survival between the two groups. The 10-year overall survival (OS) rate was 67% (95% CI, 62%–72%) in the tamoxifen-plus-radiation group, and 66% (95% CI, 61%–71%) in the tamoxifen-alone group.
2. PRIME-II was a phase III trial of radiation omission. A total of 1,326 women were randomly assigned to receive either whole-breast irradiation (n = 658) or no irradiation (n = 668). Eligible women were aged 65 years or older and had hormone receptor–positive, node-negative, T1 or T2 primary breast cancer (with tumors measuring ≤3 cm in the largest dimension). Patients had previously undergone breast-conserving surgery with clear excision margins and adjuvant endocrine therapy.[13][Level of evidence A1]
  - At a median follow-up of 10 years, the cumulative incidence of local breast cancer recurrence was 9.5% (95% CI, 6.8%–12.3%) in the no-radiation therapy group and 0.9% (95% CI, 0.1%–1.7%) in the radiation therapy group. The 10-year OS rate was almost identical in the two groups, at 80.8% (95% CI, 77.2%–84.3%) in the no-radiation therapy group and 80.7% (95% CI, 76.9%–84.3%) in the radiation therapy group.

#### Partial breast irradiation

Guidelines that address identifying appropriate candidates for partial breast irradiation have been published.[14]

Evidence (partial breast irradiation):

1. The RAPID (https://www.cancer.gov/clinicaltrials/NCT00282035) trial (NCT00282035) randomly assigned 2,135 women aged 40 years or older with ductal carcinoma in situ or node-negative breast cancer treated by breast-conserving surgery to receive either external-beam accelerated partial breast irradiation (APBI) (38.5 Gy in ten fractions delivered twice per day over 5–8 days) or whole-breast radiation therapy (42.5 Gy in 16 fractions delivered once per day over 21 days, or 50 Gy in 25 fractions once per day over 35 days).[15] Sixty-five ipsilateral breast tumor recurrences were observed, 37 in the APBI group, and 28 in the whole-breast irradiation group.
  - In patients treated with APBI, the 5-year cumulative rate of ipsilateral breast tumor recurrence was 2.3% (95% CI, 1.4%–3.2%) and the 8-year cumulative rate was 3.0% (95% CI, 1.9%–4.0%).
  - In patients treated with whole-breast radiation therapy, the 5-year cumulative rate of ipsilateral breast tumor recurrence was 1.7% (range, 0.9%–2.5%) and the 8-year cumulative rate was 2.8% (range, 1.8%–3.9%).
  - The hazard ratio (HR) for APBI versus whole-breast radiation therapy was 1.27 (90% CI, 0.84–1.91).
  - Thus, the upper bound of the estimated 90% CI did not exceed the noninferiority margin of 2.02. The APBI arm was associated with less short-term but more long-term toxicity.[15][Level of evidence B1]
2. The NSABP B-39/RTOG 0413 (https://www.cancer.gov/clinicaltrials/NCT00103181) trial (NCT00103181) randomly assigned 4,216 women to whole-breast radiation therapy or APBI.[16] Whole-breast radiation therapy was delivered in 25 daily fractions of 50 Gy over 5 weeks, with or without a supplemental boost to the tumor bed, and APBI was delivered as 34 Gy of brachytherapy or 38.5 Gy of external-bream radiation therapy in 10 fractions, over 5 treatment days within an 8-day period.
  - At a median follow-up of 10.2 years (interquartile range, 7.5–11.5), 90 of 2,089 women (4%) eligible for the primary outcome in the APBI group and 71 of 2,036 women (3%) in the whole-breast radiation therapy group had an ipsilateral breast tumor recurrence (HR, 1.22; 90% CI, 0.94–1.58). The results did not meet the prespecified criterion for equivalence, an HR of 1.50 or less.
  - Toxicity was not substantially different between the arms.[16][Level of evidence B1]
3. The randomized, phase III, single-center APBI-IMRT-Florence (https://www.cancer.gov/clinicaltrials/NCT02104895) trial (NCT02104895) evaluated differences in ipsilateral breast tumor recurrence (IBTR) among patients who received APBI using either intensity-modulated radiation therapy, an advanced radiation technique, (30 Gy in five once-daily fractions) or whole-breast radiation therapy with tangents (50 Gy in 25 fractions with a tumor bed boost). Patients had previously undergone breast-conserving surgery. A total of 520 patients were randomly assigned (whole-breast radiation therapy, n = 260; APBI, n = 260).[17]
  - The 10-year cumulative incidence of IBTR was 2.5% in the whole-breast radiation therapy arm and 3.7% in the APBI arm (HR, 1.56; 95% CI, 0.55–4.37; P = .40).
  - The 10-year OS rate was 91.9% in both arms (HR, 0.95; 95% CI, 0.50–1.79; P = .86). Breast cancer–specific survival at 10 years was 96.7% in the whole-breast radiation therapy arm and 97.8% in the APBI arm (HR, 0.65; 95% CI, 0.21–1.99; P = .45).
  - There were fewer acute and late toxicities in the APBI arm (P = .0001 for both comparisons). The APBI arm had improved cosmetic outcomes as evaluated by both physicians and patients (P = .0001 for both comparisons).

#### Regional nodal irradiation

Regional nodal irradiation is routinely given postmastectomy to patients with involved lymph nodes; however, its role in patients who have breast-conserving surgery and whole-breast radiation therapy has been less clear. A randomized trial (NCT00005957 (https://www.cancer.gov/clinicaltrials/NCT00005957)) of 1,832 women showed that administering regional nodal irradiation after breast-conserving surgery and whole-breast radiation therapy reduced the risk of recurrence (10-year disease-free survival [DFS] rate, 82.0% vs. 77.0%; HR, 0.76; 95% CI, 0.61–0.94; P = .01) but did not affect survival (10-year OS rate, 82.8% vs. 81.8%; HR, 0.91; 95% CI, 0.72–1.13; P = .38).[18][Level of evidence A1]

Similar findings were reported from the EORTC trial (NCT00002851 (https://www.cancer.gov/clinicaltrials/NCT00002851)). Women with a centrally or medially located primary tumor with or without axillary node involvement, or an externally located tumor with axillary involvement, were randomly assigned to receive whole-breast or thoracic-wall radiation therapy in addition to regional nodal irradiation or not. Breast-conserving surgery was performed for 76.1% of the study population, and the remaining participants underwent mastectomy. No improvement in OS was seen at 10 years among patients who underwent regional nodal irradiation, compared with patients who did not undergo regional nodal radiation (82.3% vs. 80.7%, P = .06). Distant DFS was improved among patients who underwent regional nodal irradiation when compared with patients who did not undergo regional nodal irradiation (78% vs. 75%, P = .02).[19][Level of evidence A1]

A meta-analysis of individual patient data from all randomized trials of regional lymph node radiation therapy versus no regional lymph node radiation therapy in women with early breast cancer included 16 clinical trials involving 14,324 participants. It found that radiation therapy significantly reduced breast cancer mortality (RR, 0.87; 95% CI, 0.80–0.94; P = .0010), with no significant effect on non–breast cancer mortality (RR, 0.97; 0.84–1.11; P = .63), leading to significantly reduced all-cause mortality (RR, 0.90; 0.84–0.96; P = .0022). Estimated absolute reductions in 15-year breast cancer mortality were 1.6% for women with zero positive axillary nodes, 2.7% for those with one to three positive axillary nodes, and 4.5% for those with four or more positive axillary nodes.[20]

#### Postmastectomy

Postoperative chest wall and regional lymph node adjuvant radiation therapy has traditionally been given to selected patients considered at high risk of locoregional failure after mastectomy. Patients at highest risk of local recurrence meet one or more of the following criteria:[21-23]

- Four or more positive axillary nodes.
- Grossly evident extracapsular nodal extension.
- Lymphovascular space invasion.
- Large primary tumors.
- Very close or positive deep margins of resection of the primary tumor.

In this high-risk group, radiation therapy can decrease locoregional recurrence, even among patients who receive adjuvant chemotherapy.[24]

Patients with one to three involved nodes without any of the high-risk factors may be at a lower risk of local recurrence, and the value of routine use of adjuvant radiation therapy in this setting is an area of controversy.

Evidence (postoperative radiation therapy in patients with one to three involved lymph nodes):

1. The 2005 EBCTCG meta-analysis of 42,000 women in 78 randomized treatment comparisons indicated that radiation therapy is beneficial, regardless of the number of lymph nodes involved.[1][Level of evidence A1]
  - For women with node-positive disease postmastectomy and axillary clearance (removal of axillary lymph nodes and surrounding fat), radiation therapy reduced the 5-year local recurrence risk from 23% to 6% (absolute gain, 17%; 95% CI, 15.2%–18.8%). This translated into a significant reduction (P = .002) in breast cancer mortality, 54.7% versus 60.1%, with an absolute gain of 5.4% (95% CI, 2.9%–7.9%).
  - In subgroup analyses, the 5-year local recurrence rate was reduced by 12% (95% CI, 8%–16%) for women with one to three involved lymph nodes and by 14% (95% CI, 10%–18%) for women with four or more involved lymph nodes. In an updated meta-analysis of 1,314 women with axillary dissection and one to three positive nodes, radiation therapy reduced locoregional recurrence (2-sided P < .00001), overall recurrence (RR, 0.68; 95% CI, 0.57–0.82; 2-sided P = .00006), and breast cancer mortality (RR, 0.80; 95% CI, 0.67–0.95; 2-sided P = .01).[25][Level of evidence A1]
  - In contrast, for women at low risk of local recurrence with node-negative disease, the absolute reduction in 5-year local recurrence was only 4% (P = .002; 95% CI, 1.8%–6.2%), and there was not a statistically significant reduction in 15-year breast cancer mortality (absolute gain, 1.0%; P > .1; 95% CI, -0.8%–2.8%).

Further, an analysis of National Surgical Adjuvant Breast and Bowel Project (NSABP) trials showed that even in patients with large (>5 cm) primary tumors and negative axillary lymph nodes, the risk of isolated locoregional recurrence was low enough (7.1%) that routine locoregional radiation therapy was not warranted.[26]

### Timing of Postoperative Radiation Therapy

The optimal sequence of adjuvant chemotherapy and radiation therapy after breast-conserving surgery has been studied. Based on studies, delaying radiation therapy for several months after breast-conserving surgery until the completion of adjuvant chemotherapy does not appear to have a negative impact on overall outcome. Additionally, initiating chemotherapy soon after breast-conserving surgery may be preferable for patients at high risk of distant dissemination.

Evidence (timing of postoperative radiation therapy):

1. In a randomized trial, patients received one of the following regimens:[27][Level of evidence A1]
  a. Chemotherapy first (n = 122), consisting of cyclophosphamide, methotrexate, fluorouracil (5-FU), and prednisone plus doxorubicin repeated every 21 days for four cycles, followed by breast radiation.
  b. Breast radiation first (n = 122), followed by the same chemotherapy.
  The following results were observed:
  - With a median follow-up of 5 years, OS was 73% for the radiation-first group and 81% for the chemotherapy-first group (P = .11).
  - The 5-year crude rate of first recurrence by site was 5% in the radiation-first group and 14% in the chemotherapy-first group for local recurrence and 32% in the radiation-first group and 20% in the chemotherapy-first group for distant or regional recurrence or both. This difference in the pattern of recurrence was of borderline statistical significance (P = .07).
  - Further analyses revealed that differences in recurrence patterns persisted for most subgroups except for those who had either negative tumor margins or one to three positive lymph nodes. For these two subgroups, sequence assignment made little difference in local or distant recurrence rates, although the statistical power of these subgroup analyses was low.
  - Potential explanations for the increase in distant recurrence noted in the radiation-first group are that chemotherapy was delayed for a median of 17 weeks after surgery, and that this group received lower chemotherapy dosages because of increased myelosuppression.
2. Two additional randomized trials, though not specifically designed to address the timing of radiation therapy and adjuvant chemotherapy, do add useful information.
  - In the NSABP-B-15 trial, patients who had undergone breast-conserving surgery received either one course of cyclophosphamide, methotrexate, and 5-FU (CMF) (n = 194) followed by radiation therapy followed by five additional cycles of CMF, or they received four cycles of doxorubicin and cyclophosphamide (n = 199) followed by radiation therapy.[28][Level of evidence A1]
    - No differences in DFS, distant DFS, and OS were observed between these two arms.
  - The International Breast Cancer Study Group trials VI and VII also varied the timing of radiation therapy with CMF adjuvant chemotherapy and reported results similar to NSABP-B-15.[29]

These studies showed that delaying radiation therapy for 2 to 7 months after surgery had no effect on the rate of local recurrence. These findings have been confirmed in a meta-analysis.[30][Level of evidence A1]

In an unplanned analysis of patients treated on a phase III trial evaluating the benefit of adding trastuzumab in HER2-positive breast cancer patients, there was no associated increase in acute adverse events or frequency of cardiac events in patients who received concurrent adjuvant radiation therapy and trastuzumab.[31] Therefore, delivering radiation therapy concomitantly with trastuzumab appears to be safe and avoids additional delay in radiation therapy treatment initiation.

### Acute and Late Toxicities of Radiation Therapy

Acute toxicities of radiation therapy include radiation dermatitis, breast swelling and/or itching, tightness in the axillary area, and fatigue. If regional nodes are being treated, patients can also experience nausea and a sore throat due to radiation esophagitis. Symptoms typically peak 1 to 2 weeks after radiation therapy, then decrease slowly over the next 4 to 6 weeks.[32]

Late toxicities of radiation therapy are uncommon and can be minimized with radiation delivery techniques and with careful delineation of the target volume. Late effects of radiation include:

- Radiation pneumonitis. In a retrospective analysis of 1,624 women treated with conservative surgery and adjuvant breast radiation at a single institution, the overall incidence of symptomatic radiation pneumonitis was 1.0% at a median follow-up of 77 months.[33] The incidence of pneumonitis increased to 3.0% with the use of a supraclavicular radiation field and to 8.8% when concurrent chemotherapy was administered. The incidence was only 1.3% in patients who received sequential chemotherapy.[33][Level of evidence C1]
- Cardiac events. Controversy existed as to whether adjuvant radiation therapy to the left chest wall or breast, with or without inclusion of the regional lymphatics, was associated with increased cardiac mortality. In women treated with radiation therapy before 1980, an increased cardiac death rate was noted after 10 to 15 years, compared with women with nonradiated or right-side-only radiated breast cancer.[24,34-36] This was probably caused by the radiation received by the left myocardium.
  Modern radiation therapy techniques introduced in the 1990s minimized deep radiation to the underlying myocardium when left-sided chest wall or left-breast radiation was used. Cardiac mortality decreased accordingly.[37,38]
  An analysis of the National Cancer Institute’s Surveillance, Epidemiology, and End Results Program (SEER) data from 1973 to 1989 that reviewed deaths caused by ischemic heart disease in women who received breast or chest wall radiation showed that since 1980, no increased death rate resulting from ischemic heart disease in women who received left chest wall or breast radiation was found.[39,40][Level of evidence C1]
  A population-based case-control study evaluated major coronary events (i.e., myocardial infarction, coronary revascularization, or death from ischemic heart disease) in 2,168 women who underwent radiation therapy for breast cancer. The study found the overall average mean dose to the whole heart was 4.9 Gy (range, 0.03–27.72). The rates of major coronary events increased linearly with the mean dose to the heart by 7.4% per Gy (95% CI, 2.9%–14.5%; P < .001), with no apparent threshold.[41]
- Arm lymphedema. Lymphedema remains a major quality-of-life concern for breast cancer patients. Single-modality treatment of the axilla (surgery or radiation) is associated with a low incidence of arm edema. In patients who receive axillary dissection, adjuvant radiation therapy increases the risk of arm edema. Edema occurs in 2% to 10% of patients who receive axillary dissection alone compared with 13% to 18% of patients who receive axillary dissection and adjuvant radiation therapy.[42-44] For more information, see Lymphedema.
- Brachial plexopathy. Radiation injury to the brachial plexus after adjuvant nodal radiation therapy is a rare clinical entity for breast cancer patients. In a single-institution study using current radiation techniques, 449 breast cancer patients treated with postoperative radiation therapy to the breast and regional lymphatics were monitored for 5.5 years to assess the rate of brachial plexus injury.[45] The diagnosis of such injury was made clinically with computed tomography to distinguish radiation injury from tumor recurrence. When 54 Gy in 30 fractions was delivered to the regional nodes, the incidence of symptomatic brachial plexus injury was 1.0%, compared with 5.9% when increased fraction sizes (45 Gy in 15 fractions) were used.
- Contralateral breast cancer. One report suggested an increase in contralateral breast cancer for women younger than 45 years who received chest wall radiation therapy after mastectomy.[46] No increased risk of contralateral breast cancer occurred in women aged 45 years and older who received radiation therapy.[47] Techniques to minimize the radiation dose to the contralateral breast are used to keep the absolute risk as low as possible.[48]
- Risk of second malignancy. The rate of second malignancy after adjuvant radiation therapy is very low. Sarcomas in the treated field are rare, with a long-term risk of 0.2% at 10 years.[49] In nonsmokers, the risk of lung cancer as a result of radiation exposure during treatment is minimal when current dosimetry techniques are used. Smokers, however, may have a small increased risk of lung cancer in the ipsilateral lung.[50]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Clarke M, Collins R, Darby S, et al.: Effects of radiotherapy and of differences in the extent of surgery for early breast cancer on local recurrence and 15-year survival: an overview of the randomised trials. Lancet 366 (9503): 2087-106, 2005.16360786
Eifel P, Axelson JA, Costa J, et al.: National Institutes of Health Consensus Development Conference Statement: adjuvant therapy for breast cancer, November 1-3, 2000. J Natl Cancer Inst 93 (13): 979-89, 2001.11438563
Darby S, McGale P, Correa C, et al.: Effect of radiotherapy after breast-conserving surgery on 10-year recurrence and 15-year breast cancer death: meta-analysis of individual patient data for 10,801 women in 17 randomised trials. Lancet 378 (9804): 1707-16, 2011.22019144
Romestaing P, Lehingue Y, Carrie C, et al.: Role of a 10-Gy boost in the conservative treatment of early breast cancer: results of a randomized clinical trial in Lyon, France. J Clin Oncol 15 (3): 963-8, 1997.9060534 97213845
Bartelink H, Horiot JC, Poortmans P, et al.: Recurrence rates after treatment of breast cancer with standard radiotherapy with or without additional radiation. N Engl J Med 345 (19): 1378-87, 2001.11794170 21533092
Bartelink H, Maingon P, Poortmans P, et al.: Whole-breast irradiation with or without a boost for patients treated with breast-conserving surgery for early breast cancer: 20-year follow-up of a randomised phase 3 trial. Lancet Oncol 16 (1): 47-56, 2015.25500422
Wazer DE, Kramer B, Schmid C, et al.: Factors determining outcome in patients treated with interstitial implantation as a radiation boost for breast conservation therapy. Int J Radiat Oncol Biol Phys 39 (2): 381-93, 1997.9308942 97452528
King MT, Link EK, Whelan TJ, et al.: Quality of life after breast-conserving therapy and adjuvant radiotherapy for non-low-risk ductal carcinoma in situ (BIG 3-07/TROG 07.01): 2-year results of a randomised, controlled, phase 3 trial. Lancet Oncol 21 (5): 685-698, 2020.32203696
Whelan TJ, Pignol JP, Levine MN, et al.: Long-term results of hypofractionated radiation therapy for breast cancer. N Engl J Med 362 (6): 513-20, 2010.20147717
Haviland JS, Owen JR, Dewar JA, et al.: The UK Standardisation of Breast Radiotherapy (START) trials of radiotherapy hypofractionation for treatment of early breast cancer: 10-year follow-up results of two randomised controlled trials. Lancet Oncol 14 (11): 1086-94, 2013.24055415
Hickey BE, James ML, Lehman M, et al.: Fraction size in radiation therapy for breast conservation in early breast cancer. Cochrane Database Syst Rev 7: CD003860, 2016.27425588
Hughes KS, Schnaper LA, Bellon JR, et al.: Lumpectomy plus tamoxifen with or without irradiation in women age 70 years or older with early breast cancer: long-term follow-up of CALGB 9343. J Clin Oncol 31 (19): 2382-7, 2013.23690420
Kunkler IH, Williams LJ, Jack WJL, et al.: Breast-Conserving Surgery with or without Irradiation in Early Breast Cancer. N Engl J Med 388 (7): 585-594, 2023.36791159
Shaitelman SF, Anderson BM, Arthur DW, et al.: Partial Breast Irradiation for Patients With Early-Stage Invasive Breast Cancer or Ductal Carcinoma In Situ: An ASTRO Clinical Practice Guideline. Pract Radiat Oncol 14 (2): 112-132, 2024.37977261
Whelan TJ, Julian JA, Berrang TS, et al.: External beam accelerated partial breast irradiation versus whole breast irradiation after breast conserving surgery in women with ductal carcinoma in situ and node-negative breast cancer (RAPID): a randomised controlled trial. Lancet 394 (10215): 2165-2172, 2019.31813635
Vicini FA, Cecchini RS, White JR, et al.: Long-term primary results of accelerated partial breast irradiation after breast-conserving surgery for early-stage breast cancer: a randomised, phase 3, equivalence trial. Lancet 394 (10215): 2155-2164, 2019.31813636
Meattini I, Marrazzo L, Saieva C, et al.: Accelerated Partial-Breast Irradiation Compared With Whole-Breast Irradiation for Early Breast Cancer: Long-Term Results of the Randomized Phase III APBI-IMRT-Florence Trial. J Clin Oncol 38 (35): 4175-4183, 2020.32840419
Whelan TJ, Olivotto IA, Parulekar WR, et al.: Regional Nodal Irradiation in Early-Stage Breast Cancer. N Engl J Med 373 (4): 307-16, 2015.26200977
Poortmans PM, Collette S, Kirkove C, et al.: Internal Mammary and Medial Supraclavicular Irradiation in Breast Cancer. N Engl J Med 373 (4): 317-27, 2015.26200978
Early Breast Cancer Trialists' Collaborative Group (EBCTCG): Radiotherapy to regional nodes in early breast cancer: an individual patient data meta-analysis of 14 324 women in 16 trials. Lancet 402 (10416): 1991-2003, 2023.37931633
Ragaz J, Jackson SM, Le N, et al.: Adjuvant radiotherapy and chemotherapy in node-positive premenopausal women with breast cancer. N Engl J Med 337 (14): 956-62, 1997.9309100 97441017
Overgaard M, Hansen PS, Overgaard J, et al.: Postoperative radiotherapy in high-risk premenopausal women with breast cancer who receive adjuvant chemotherapy. Danish Breast Cancer Cooperative Group 82b Trial. N Engl J Med 337 (14): 949-55, 1997.9395428 97441016
Fowble B, Gray R, Gilchrist K, et al.: Identification of a subgroup of patients with breast cancer and histologically positive axillary nodes receiving adjuvant chemotherapy who may benefit from postoperative radiotherapy. J Clin Oncol 6 (7): 1107-17, 1988.3292711 88274488
Favourable and unfavourable effects on long-term survival of radiotherapy for early breast cancer: an overview of the randomised trials. Early Breast Cancer Trialists' Collaborative Group. Lancet 355 (9217): 1757-70, 2000.10832826 20290423
McGale P, Taylor C, Correa C, et al.: Effect of radiotherapy after mastectomy and axillary surgery on 10-year recurrence and 20-year breast cancer mortality: meta-analysis of individual patient data for 8135 women in 22 randomised trials. Lancet 383 (9935): 2127-35, 2014.24656685
Taghian AG, Jeong JH, Mamounas EP, et al.: Low locoregional recurrence rate among node-negative breast cancer patients with tumors 5 cm or larger treated by mastectomy, with or without adjuvant systemic therapy and without radiotherapy: results from five national surgical adjuvant breast and bowel project randomized clinical trials. J Clin Oncol 24 (24): 3927-32, 2006.16921044
Recht A, Come SE, Henderson IC, et al.: The sequencing of chemotherapy and radiation therapy after conservative surgery for early-stage breast cancer. N Engl J Med 334 (21): 1356-61, 1996.8614420 96204521
Fisher B, Brown AM, Dimitrov NV, et al.: Two months of doxorubicin-cyclophosphamide with and without interval reinduction therapy compared with 6 months of cyclophosphamide, methotrexate, and fluorouracil in positive-node breast cancer patients with tamoxifen-nonresponsive tumors: results from the National Surgical Adjuvant Breast and Bowel Project B-15. J Clin Oncol 8 (9): 1483-96, 1990.2202791 90362164
Wallgren A, Bernier J, Gelber RD, et al.: Timing of radiotherapy and chemotherapy following breast-conserving surgery for patients with node-positive breast cancer. International Breast Cancer Study Group. Int J Radiat Oncol Biol Phys 35 (4): 649-59, 1996.8690630 96305150
Hickey BE, Francis DP, Lehman M: Sequencing of chemotherapy and radiotherapy for early breast cancer. Cochrane Database Syst Rev 4: CD005212, 2013.23633328
Halyard MY, Pisansky TM, Dueck AC, et al.: Radiotherapy and adjuvant trastuzumab in operable breast cancer: tolerability and adverse event data from the NCCTG Phase III Trial N9831. J Clin Oncol 27 (16): 2638-44, 2009.19349549
Lapen K, Sabol C, Tin AL, et al.: Development and Pilot Implementation of a Remote Monitoring System for Acute Toxicity Using Electronic Patient-Reported Outcomes for Patients Undergoing Radiation Therapy for Breast Cancer. Int J Radiat Oncol Biol Phys 111 (4): 979-991, 2021.34314814
Lingos TI, Recht A, Vicini F, et al.: Radiation pneumonitis in breast cancer patients treated with conservative surgery and radiation therapy. Int J Radiat Oncol Biol Phys 21 (2): 355-60, 1991.2061112 91285936
Paszat LF, Mackillop WJ, Groome PA, et al.: Mortality from myocardial infarction after adjuvant radiotherapy for breast cancer in the surveillance, epidemiology, and end-results cancer registries. J Clin Oncol 16 (8): 2625-31, 1998.9704712 98368410
Rutqvist LE, Johansson H: Mortality by laterality of the primary tumour among 55,000 breast cancer patients from the Swedish Cancer Registry. Br J Cancer 61 (6): 866-8, 1990.2372488 90321828
Darby SC, McGale P, Taylor CW, et al.: Long-term mortality from heart disease and lung cancer after radiotherapy for early breast cancer: prospective cohort study of about 300,000 women in US SEER cancer registries. Lancet Oncol 6 (8): 557-65, 2005.16054566
Højris I, Overgaard M, Christensen JJ, et al.: Morbidity and mortality of ischaemic heart disease in high-risk breast-cancer patients after adjuvant postmastectomy systemic treatment with or without radiotherapy: analysis of DBCG 82b and 82c randomised trials. Radiotherapy Committee of the Danish Breast Cancer Cooperative Group. Lancet 354 (9188): 1425-30, 1999.10543669 20009014
Nixon AJ, Manola J, Gelman R, et al.: No long-term increase in cardiac-related mortality after breast-conserving surgery and radiation therapy using modern techniques. J Clin Oncol 16 (4): 1374-9, 1998.9552040 98211766
Giordano SH, Kuo YF, Freeman JL, et al.: Risk of cardiac death after adjuvant radiotherapy for breast cancer. J Natl Cancer Inst 97 (6): 419-24, 2005.15770005
Harris EE, Correa C, Hwang WT, et al.: Late cardiac mortality and morbidity in early-stage breast cancer patients after breast-conservation treatment. J Clin Oncol 24 (25): 4100-6, 2006.16908933
Darby SC, Ewertz M, McGale P, et al.: Risk of ischemic heart disease in women after radiotherapy for breast cancer. N Engl J Med 368 (11): 987-98, 2013.23484825
Meek AG: Breast radiotherapy and lymphedema. Cancer 83 (12 Suppl American): 2788-97, 1998.9874399 99089795
Larson D, Weinstein M, Goldberg I, et al.: Edema of the arm as a function of the extent of axillary surgery in patients with stage I-II carcinoma of the breast treated with primary radiotherapy. Int J Radiat Oncol Biol Phys 12 (9): 1575-82, 1986.3759582 87007847
Swedborg I, Wallgren A: The effect of pre- and postmastectomy radiotherapy on the degree of edema, shoulder-joint mobility, and gripping force. Cancer 47 (5): 877-81, 1981.7013962 81185928
Powell S, Cooke J, Parsons C: Radiation-induced brachial plexus injury: follow-up of two different fractionation schedules. Radiother Oncol 18 (3): 213-20, 1990.2217869 91018441
Boice JD, Harvey EB, Blettner M, et al.: Cancer in the contralateral breast after radiotherapy for breast cancer. N Engl J Med 326 (12): 781-5, 1992.1538720 92168075
Storm HH, Andersson M, Boice JD, et al.: Adjuvant radiotherapy and risk of contralateral breast cancer. J Natl Cancer Inst 84 (16): 1245-50, 1992.1640483 92349455
Fraass BA, Roberson PL, Lichter AS: Dose to the contralateral breast due to primary breast irradiation. Int J Radiat Oncol Biol Phys 11 (3): 485-97, 1985.3972661 85130421
Taghian A, de Vathaire F, Terrier P, et al.: Long-term risk of sarcoma following radiation treatment for breast cancer. Int J Radiat Oncol Biol Phys 21 (2): 361-7, 1991.1648044 91285937
Inskip PD, Stovall M, Flannery JT: Lung cancer risk and radiation dose among women treated for breast cancer. J Natl Cancer Inst 86 (13): 983-8, 1994.8007020 94275898

## Systemic Therapy for Stages I, II, and III Breast Cancer

The first decision about the use of systemic therapy in patients with stages I, II and III breast cancer is whether it should be given before or after surgery. This section outlines factors to consider when making this decision. Information about the treatment of locally advanced or inflammatory breast cancer is also included in this section.

Preoperative chemotherapy, also known as primary or neoadjuvant chemotherapy, has traditionally been given to patients with locally advanced breast cancer to reduce tumor volume and allow for definitive surgery. Treatment with preoperative chemotherapy can also allow for breast conservation therapy in patients who are not candidates for breast conservation at initial presentation. Preoperative chemotherapy may also reduce the need for an axillary lymph node dissection (ALND) in patients presenting with node-positive disease.

Much of the evidence presented in the following sections on preoperative chemotherapy is discussed in an American Society of Clinical Oncology guideline that describes the selection of options for the management of these patients.[1]

A 2005 meta-analysis of multiple randomized clinical trials demonstrated that preoperative chemotherapy is associated with identical disease-free survival (DFS) and overall survival (OS) as the same therapy in the adjuvant setting.[2][Level of evidence A1]

In 2019, the Early Breast Cancer Trialists’ Collaborative Group performed a meta-analysis using individual patient data from 4,756 women who participated in 10 trials that compared neoadjuvant chemotherapy with the same regimen given in the adjuvant setting.[3] Compared with adjuvant therapy, neoadjuvant therapy was associated with an increased frequency of breast conservation (65% vs. 49%). There were no differences between neoadjuvant chemotherapy and adjuvant therapy in distant recurrence, breast cancer mortality, or death from any cause. However, neoadjuvant therapy was associated with higher 15-year local recurrence rates (21.4% vs. 15.9%; relative risk [RR], 1.37; 95% confidence interval [CI], 1.17−1.61; P = .001).[3][Level of evidence A1]

Pathological complete response (pCR) has been used as a surrogate end point for long-term outcomes, such as DFS, event-free survival (EFS), and OS, in preoperative clinical trials in breast cancer. A pooled analysis (CTNeoBC) of 11 preoperative randomized trials (n = 11,955) determined that pCR, defined as no residual invasive cancer in the breast and axillary nodes with presence or absence of in situ cancer (ypT0/is ypN0 or ypT0 ypN0), was associated with improved outcomes compared with eradication of invasive tumor from the breast alone (ypT0/is).[4] pCR could not be validated in this study as a surrogate end point for improved EFS and OS.[4][Level of evidence C2] Because of a strong association between pCR and substantially improved outcomes in individual patients with more aggressive subtypes of breast cancer, the U.S. Food and Drug Administration (FDA) has supported use of pCR as an end point in preoperative clinical trials for patients with high-risk, early-stage breast cancer.

Unfortunately, categorizing patients as having pCR or residual disease offers no distinction among patients with varied amounts of residual disease. The residual cancer burden (RCB) method was designed to address this and other prognostic deficits. The RCB method provides a standard to evaluate and quantify the extent of residual disease in breast and axillary lymph nodes following neoadjuvant chemotherapy. It is reported as a continuous score, with pCR being scored as RCB-0. There are four RCB classes ranging from RCB-0 to RCB-3. Determining RCB after neoadjuvant treatment has been validated as a prognostic predictor in early breast cancer.

A pooled, multinational, multi-institutional analysis was performed, using participant-level RCB results and clinicopathological data. Data from 5,161 patients were analyzed to assess the association between the continuous RCB score and the primary study outcome, EFS. With a median follow-up of 56 months, the RCB score was prognostic within each breast cancer subtype, with a higher RCB score significantly associated with worse EFS. RCB score was prognostic for EFS in multivariable models adjusted for age, grade, T (tumor) category, and nodal status at baseline. The adjusted hazard ratio (HR) associated with a one-unit increase in RCB ranged from 1.52 in the HER2-negative hormone receptor–positive group to 2.09 in the HER2-positive hormone receptor–negative group (P < .0001 for all subtypes).[5]

Neoadjuvant therapy is particularly favored in patients with triple-negative or HER2-positive disease, when pathological response is used as a guide in choosing the optimal adjuvant therapy after surgery. For more information, see the sections on Stages I, II, and III Triple-Negative Breast Cancer and Stages I, II, and III HER2-Positive Breast Cancer.

Omission of postoperative radiation therapy to the regional nodes in patients who initially present as node positive and become node negative after neoadjuvant therapy is currently being evaluated.

### Patient Selection, Staging, Treatment, and Follow-Up

Multidisciplinary management of patients undergoing preoperative therapy by an experienced team is essential to optimize the following:

- Patient selection.
- Choice of systemic therapy.
- Management of the axilla and surgical approach.
- Decision to administer adjuvant radiation therapy.

The tumor histology, grade, and hormone receptor status are carefully evaluated before preoperative therapy is initiated. Patients whose tumors have a pure lobular histology, low grade, or high hormone receptor expression and HER2-negative status are less likely to respond to chemotherapy and should consider primary surgery, especially if the nodes are clinically negative. Even if adjuvant chemotherapy is given after surgery in these cases, a third-generation regimen (anthracycline/taxane based) may be avoided.

Before beginning preoperative therapy, the extent of the disease within the breast and regional lymph nodes should be assessed. Staging of systemic disease may include:[6]

- Computed tomography scan of the chest and abdomen and a bone scan.
- Positron emission tomography.

When breast-conserving therapy is desired, baseline breast imaging is performed to identify the tumor location and exclude multicentric disease. Suspicious abnormalities are usually biopsied before beginning treatment, and a marker is placed at the center of the breast tumor(s). When possible, suspicious axillary nodes should be biopsied before initiation of systemic treatment.

In patients with clinically negative nodes who receive neoadjuvant chemotherapy, a sentinel lymph node (SLN) biopsy is typically performed at the time of surgery. In patients presenting with positive lymph nodes, detected by either clinical examination or imaging, SLN biopsy may be performed in a patient who becomes clinically node negative after preoperative therapy.[7] The use of dual mapping with both radiocolloid and blue dye and retrieval of at least three negative lymph nodes was associated with a lower false-negative rate and ALND may be omitted in these patients.[8][Level of evidence B4]; [9][Level of evidence C2]; [10][Level of evidence C3]

When considering preoperative therapy, treatment options include:

- For HER2-negative breast tumors, an anthracycline/taxane-based chemotherapy regimen.
- For HER2-positive disease, chemotherapy and HER2-targeted therapy.
- Ideally, the entire treatment regimen is administered before surgery.
- For postmenopausal women with hormone receptor–positive breast cancer, chemotherapy is an option. For those who cannot be given chemotherapy, preoperative endocrine therapy may be an option.
- For premenopausal women with hormone-responsive cancer, the use of preoperative endocrine therapy is under investigation.

Regular clinical assessment of response to therapy is necessary after beginning preoperative therapy. Repeat radiographic assessment is also required if breast conservation is the surgical goal. Patients with progressive disease during preoperative therapy may either transition to a non–cross-resistant regimen or proceed to surgery, if feasible.[11,12] Although switching to a non–cross-resistant regimen results in a higher pCR rate than continuing the same therapy, there is no clear evidence that other breast cancer outcomes are improved with this approach.

### Stages I, II, and III HER2-Negative Hormone Receptor–Positive Breast Cancer

Most studies that support the use of chemotherapy were conducted after patients had surgery and prior to the widespread use of preoperative therapy. In general, their results are still applicable to preoperative treatment, and these regimens are the ones most commonly used in the neoadjuvant space for this subtype. The following section describes studies that examined the use of chemotherapy in the preoperative setting.

Early trials examined whether anthracycline-based regimens used in the adjuvant setting would prolong DFS and OS when used in the preoperative setting. The evidence supports higher rates of breast-conserving therapy with the use of a preoperative anthracycline chemotherapy regimen than with postoperative use, but no improvement in survival was noted with the preoperative strategy.

Typically, an anthracycline-and-taxane–based regimen is used if chemotherapy is administered in the neoadjuvant setting for patients with HER2-negative breast cancer.

Evidence (anthracycline/taxane–based chemotherapy regimen):

1. In an effort to improve on the results observed with doxorubicin and cyclophosphamide (AC) alone, the NSABP B-27 (https://www.cancer.gov/clinicaltrials/NCT00002707) trial (NCT00002707) was conducted. Patients were randomly assigned to receive (1) four cycles of preoperative AC followed by surgery, (2) four cycles of AC followed by four cycles of docetaxel and then surgery, or (3) four cycles of AC followed by surgery and then four cycles of docetaxel.[13][Level of evidence B1]
  - The administration of preoperative AC followed by docetaxel was associated with a higher clinical complete response rate compared with the administration of AC alone (63.6% for AC followed by docetaxel and 40.1% for AC alone; P < .001); a higher pCR rate was also observed (26.1% for AC followed by docetaxel and 13.7% for AC alone; P < .001).
2. Data from NSABP B-27 and the Aberdeen Breast Group Trial support the use of anthracycline/taxane–based regimens in women with initial response or with relative resistance to anthracyclines.[11]
3. Alternative anthracycline/taxane schedules have also been evaluated (concurrent docetaxel, doxorubicin, and cyclophosphamide) and appear similar in efficacy to the sequential approach described above.[14][Level of evidence B3]
4. The phase III GeparSepto (https://www.cancer.gov/clinicaltrials/NCT01583426) trial (NCT01583426) investigated an alternative taxane (nab-paclitaxel) in patients with untreated primary breast cancer.[15] Patients (n = 1,229) were randomly assigned to receive 12 weeks of nab-paclitaxel or paclitaxel followed by epirubicin and cyclophosphamide for four cycles.
  - The pCR rate was higher in the nab-paclitaxel arm (233 patients, 38%; 95% CI, 35%–42%) when compared with the paclitaxel arm (174 patients, 29%; 95% CI, 25%–33%).[15][Level of evidence B3]
  - However, in the ETNA (https://www.cancer.gov/clinicaltrials/NCT01822314) trial (NCT01822314) that compared neoadjuvant nab-paclitaxel with paclitaxel followed by anthracycline-based therapy, no significant difference in pCR was observed, and neutropenia and peripheral neuropathy were more frequent in the nab-paclitaxel arm.[16]
  - Differences in taxane dose and schedule may explain the different findings in the GeparSepto and ETNA trials.
5. The incorporation of other cytotoxic agents to anthracycline/taxane–based regimens has not offered a significant additional benefit to breast conservation or pCR rate in unselected breast cancer populations.[17][Level of evidence B3]

#### Preoperative endocrine therapy for HER2-negative hormone receptor–positive breast cancer

Preoperative endocrine therapy may be an option for postmenopausal women with hormone receptor–positive breast cancer when chemotherapy is not a suitable option because of comorbidities or performance status. Although the toxicity profile of preoperative hormonal therapy over the course of 3 to 6 months is favorable, the pCR rates obtained (1%–8%) are far lower than have been reported with chemotherapy in unselected populations.[18][Level of evidence B3]

Longer duration of preoperative therapy may be required in this patient population. Preoperative tamoxifen was associated with an overall response rate of 33%, with maximum response occurring up to 12 months after therapy in some patients.[19] A randomized study of 4, 8, or 12 months of preoperative letrozole in older patients who were not fit for chemotherapy indicated that the longer duration of therapy resulted in the highest pCR rate (17.5% vs. 5% vs. 2.5%, P-value for trend < .04).[20][Level of evidence B3]

Aromatase inhibitors (AIs) have also been compared with tamoxifen in the preoperative setting. Overall objective response and breast-conserving therapy rates with 3 to 4 months of preoperative therapy were either statistically significantly improved in the AI-treated women [18] or comparable to tamoxifen-associated outcomes.[20]

The use of preoperative endocrine therapy in premenopausal women with hormone-responsive breast cancer remains investigational.

#### Postoperative systemic therapy for HER2-negative hormone receptor–positive breast cancer

Stage and molecular features determine the need for adjuvant systemic therapy and the choice of modalities for patients who have not been treated with preoperative systemic therapy. The selection of therapy is most appropriately based on knowledge of an individual’s risk of tumor recurrence balanced against the short-term and long-term risks of adjuvant treatment. This approach allows clinicians to help individuals determine if the gains anticipated from treatment are reasonable for their situation.

##### Anthracycline-containing chemotherapy

An Early Breast Cancer Trialists' Collaborative Group (EBCTCG) meta-analysis included 11 trials that began from 1976 to 1989 in which women were randomly assigned to receive regimens containing anthracyclines (e.g., doxorubicin or epirubicin) or CMF (cyclophosphamide, methotrexate, and fluorouracil [5-FU]). The result of the overview analysis comparing CMF and anthracycline-containing regimens suggested a slight advantage for the anthracycline regimens in both premenopausal and postmenopausal women. The HER2 status of the women in these trials was unknown.[21]

Several trials have addressed the benefit of adding a taxane (paclitaxel or docetaxel) to an anthracycline-based adjuvant chemotherapy regimen.[22-26]

A literature-based meta-analysis of 13 studies demonstrated that the inclusion of a taxane improved both DFS and OS (DFS: HR, 0.83; 95% CI, 0.79–0.87; P < .001; OS: HR, 0.85; 95% CI, 0.79–0.91; P < .001). Five-year absolute survival differences were 5% for DFS and 3% for OS, in favor of taxane-containing regimens.[22][Level of evidence A1]

A number of studies have addressed the optimal chemotherapy schedule and taxane selection.

An Eastern Cooperative Oncology Group–led intergroup trial (E1199 (https://www.cancer.gov/clinicaltrials/NCT00004125) [NCT00004125]) involving 4,950 patients compared, in a factorial design, two schedules (weekly and every 3 weeks) of the two drugs (docetaxel vs. paclitaxel) after standard-dose AC chemotherapy given every 3 weeks.[27][Level of evidence A1] Study findings include the following:

- There was no difference observed in the overall comparison of docetaxel to paclitaxel with regard to DFS (odds ratio [OR], 1.03; 95% CI, 0.91–1.16; P = .61) or between the 1-week and 3-week schedules (OR, 1.06; 95% CI, 0.94–1.20; P = .33).
- There was a significant association between the drug administered and schedule for both DFS (0.003) and OS (0.01). Thus, compared with paclitaxel given every 3 weeks, paclitaxel given weekly improved both DFS (OR, 1.27; 95% CI, 1.01–1.57; P = .006) and OS (OR, 1.32; 95% CI, 1.02–1.72; P = .01).
- Docetaxel given every 3 weeks was also superior in DFS to paclitaxel given every 3 weeks (OR, 1.23; 95% CI, 1.00–1.52; P = .02), but the difference was not statistically significant for OS (OR, 1.13; 95% CI, 0.88–1.46; P = .25).
- Docetaxel given weekly was not superior to paclitaxel given every 3 weeks. There was no stated a priori basis for expecting that varying the schedule of administration would have opposite effects for the two drugs.

Several studies sought to determine whether decreasing the duration between chemotherapy cycles could improve clinical outcomes. The overall results of these studies support the use of dose-dense chemotherapy for women with HER2-negative breast cancer.

Evidence (administration of dose-dense chemotherapy in women with HER2-negative breast cancer):

1. A U.S. intergroup trial (CALGB-9741 (https://www.cancer.gov/clinicaltrials/NCT00003088) [NCT00003088]) of 2,005 node-positive patients compared, in a 2 × 2 factorial design, the use of concurrent AC followed by paclitaxel with sequential doxorubicin, paclitaxel, and cyclophosphamide given every 2 weeks with filgrastim or every 3 weeks.[28][Level of evidence A1]
  - At a median follow-up of 68 months, dose-dense treatment improved DFS, the primary end point, in all patient populations (HR, 0.80; P = .018), but not OS (HR, 0.85; P = .12).[29][Level of evidence A1]
  - There was no interaction between density and sequence.
  - Severe neutropenia was less frequent in patients who received the dose-dense regimens.[30][Level of evidence A1]
2. An Italian trial (NCT00433420 (https://www.cancer.gov/clinicaltrials/NCT00433420)) compared two versus three weekly doses of epirubicin plus cyclophosphamide (with or without 5-FU) in a factorial design, with a result similar to a U.S. intergroup trial; however, this trial also demonstrated a difference in OS.[31]
  - For the dose-density comparison, the 5-year DFS rate was 81% (95% CI, 79%–84%) in patients treated every 2 weeks and 76% (95% CI, 74%–79%) in patients treated every 3 weeks (HR, 0.77; 95% CI, 0.65–0.92; P = .004).
  - Five-year OS rates were 94% (95% CI, 93%–96%) and 89% (95% CI, 87%–91%; HR, 0.65; 0.51–0.84; P = .001).[31][Level of evidence A1]
3. A meta-analysis of 26 randomized trials that included 37,298 women treated with anthracycline- and taxane-containing chemotherapy compared standard regimens (given every 3–4 weeks) with more dose-intense regimens. Regimens that increased dose intensity by shortening the interval between cycles (i.e., dose-dense therapy or administration of the same dose over a shorter time period) and regimens that increased dose intensity by administering individual drugs in sequence to allow for higher doses (i.e., sequential scheduling).[32]
  - Patients who received more dose-intense regimens had superior recurrence-free survival (RFS) (28.0% vs. 31.4%; RR, 0.86; 95% CI, 0.82–0.89; P < .0001) and OS (18.9% vs. 21.3%; RR, 0.87; 95% CI, 0.83–0.92; P < .0001) at 10 years. The difference was present and statistically significant in receptor-positive and receptor-negative subgroups.

##### Non–anthracycline-containing regimens

Because of potential long-term toxicities from anthracyclines, the efficacy and toxicity of non–anthracycline-containing regimens have been studied. For more information, see the Toxicity of Adjuvant Chemotherapy section.

Data are inconsistent regarding whether an anthracycline-containing regimen is more efficacious than a non–anthracycline-containing regimen. Both types of regimens are acceptable, and the choice must be individualized on the basis of risk and other patient characteristics.

Evidence (non–anthracycline-containing regimens):

1. The ABC trials were three open-label, randomized, phase III trials comparing TC (taxane and cyclophosphamide) with regimens containing an anthracycline/cyclophosphamide plus a taxane (TaxAC) for the adjuvant treatment of patients with HER2-negative early-stage breast cancer.[33] The three trials were analyzed together with a primary end point of invasive disease-free survival (IDFS). The primary aim was to determine if TC (the non-anthracycline arm) was noninferior to the TaxAC arms. Inferiority for TC was predefined as an HR exceeding 1.18 for the TC versus TaxAC arms. Participants were randomly assigned to receive TC (n = 2, 125) or TaxAC (n = 2,127).
  - In an interim futility analysis, the HR for IDFS was 1.202 (95% CI, 0.97–1.49) for TC versus TaxAC, which exceeded the predetermined limit to define TC as inferior.
  - The 4-year IDFS rate was 88.2% for patients who received TC and 90.7% for patients who received TaxAC (P = .04).
  - Although the findings favored treatment with regimens containing an anthracycline/cyclophosphamide plus a taxane, absolute differences between TC and TaxAC were small. Exploratory analyses suggested the greatest benefits from the TaxAC regimens were seen in patients with triple-negative disease and hormone receptor–positive disease with involved axillary lymph nodes, supporting a role for non–anthracycline-containing regimens in patients with lower-risk disease.
2. The West German Plan B (https://www.cancer.gov/clinicaltrials/NCT01049425) trial (NCT01049425) randomly assigned 2,499 women with node-positive or high-risk node-negative disease to receive either four cycles of epirubicin/cyclophosphamide plus four cycles of docetaxel (EC-T) or six cycles of TC.[34] After an early amendment, women with hormone receptor–positive disease and a recurrence score below 12 were excluded.
  - After a median follow-up of 60 months, 5-year outcomes were similar in the EC-T and TC arms for DFS (HR, 1.004; 95% CI, 0.776–1.299) and OS (HR, 0.937; 95% CI, 0.654–1.342).[34][Level of evidence B1]
  - The upper 90% confidence limit for DFS did not exceed the noninferiority boundary of 1.467.
  - There were five treatment-related deaths among patients who received TC and one death among those who received EC-T, but symptomatic adverse events were more frequent in patients who received EC-T.

#### Timing of postoperative chemotherapy

The optimal time to initiate adjuvant therapy is uncertain. Studies have reported the following:

1. A retrospective, observational, single-institution study of patients with early-stage breast cancer who were diagnosed between 1997 and 2011 revealed that delays in initiation of adjuvant chemotherapy adversely affected survival outcomes.[35][Level of evidence C1]
  - Initiation of chemotherapy 61 days or more after surgery was associated with adverse outcomes among patients with stage II breast cancer (distant RFS [DRFS]: HR, 1.20; 95% CI, 1.02–1.43) and stage III breast cancer (OS: HR, 1.76; 95% CI, 1.26–2.46; RFS: HR, 1.34; 95% CI, 1.01–1.76; and DRFS: HR, 1.36; 95% CI, 1.02–1.80).
  - Patients with triple-negative breast cancer (TNBC) and those with HER2-positive tumors treated with trastuzumab who started chemotherapy 61 days or more after surgery had worse survival (TNBC: HR, 1.54; 95% CI, 1.09–2.18; HER2-positive: HR, 3.09; 95% CI, 1.49–6.39) than did those who initiated treatment in the first 30 days after surgery.
  - Because of the weaknesses and limitations of this study design, the optimal time to initiate adjuvant chemotherapy remains uncertain.
2. A population-based study from California included 24,843 patients and found that delays in initiating adjuvant chemotherapy of 90 days or less had no impact on OS, but found a substantial effect for delays over 90 days (HR, 1.27; 95% CI, 1.05–1.53), particularly among patients with TNBC.[36][Level of evidence C1]
3. Multiple other studies have examined the effect of treatment delays of 90 days or less and have reported inconsistent results, with the possible exception of patients with TNBC.[36]

##### Endocrine therapy

Much of the evidence presented in the following sections on therapy for women with hormone receptor–positive disease has been considered in an American Society of Clinical Oncology guideline that describes several options for the management of these patients.[37] Five years of adjuvant endocrine therapy has been shown to substantially reduce the risks of locoregional and distant recurrence, contralateral breast cancer, and death from breast cancer.

The optimal duration of endocrine therapy is unclear, with the preponderance of evidence supporting at least 5 years of endocrine therapy. A meta-analysis of 88 clinical trials involving 62,923 women with hormone receptor–positive breast cancer who were disease free after 5 years of endocrine therapy showed a steady risk of late recurrence 5 to 20 years after diagnosis.[38][Level of evidence C2] The risk of distant recurrence correlated with the original tumor (T) and node (N) status, with risks ranging from 10% to 41%.

###### Tamoxifen

Tamoxifen has been shown to benefit women with hormone receptor–positive breast cancer.

Evidence (tamoxifen for hormone receptor–positive early breast cancer):

1. The EBCTCG performed a meta-analysis of systemic treatment of early breast cancer by hormone, cytotoxic, or biological therapy methods in randomized trials involving 144,939 women with stage I or stage II breast cancer. An analysis published in 2005 included information on 80,273 women in 71 trials of adjuvant tamoxifen.[21][Level of evidence A1]
  - In this analysis, the benefit of tamoxifen was found to be restricted to women with hormone receptor–positive or hormone receptor–unknown breast tumors. In these women, the 15-year absolute reduction associated with 5 years of use was 12% for recurrence and 9% for mortality.
  - Allocation to approximately 5 years of adjuvant tamoxifen reduces the annual breast cancer death rate by 31%, largely irrespective of the use of chemotherapy, age (<50 years, 50–69 years, ≥70 years), progesterone receptor (PR) status, or other tumor characteristics.
  - The meta-analysis also confirmed the benefit of adjuvant tamoxifen in hormone receptor–positive premenopausal women. Women younger than 50 years obtained a degree of benefit from 5 years of tamoxifen similar to that obtained by older women. In addition, the proportional reductions in both recurrence and mortality associated with tamoxifen use were similar in women with either node-negative or node-positive breast cancer, but the absolute improvement in survival at 10 years was greater in the node-positive breast cancer group (5.3% vs. 12.5% with 5 years of use).
2. Similar results were found in the IBCSG-13-93 trial.[39] Of 1,246 women with stage II disease, only the women with hormone receptor–positive disease benefited from tamoxifen.

The optimal duration of tamoxifen use has been addressed by the EBCTCG meta-analysis and by several large randomized trials.[21,40-43] Ten years of tamoxifen therapy has shown superiority to shorter durations of tamoxifen therapy.

Evidence (duration of tamoxifen therapy):

1. The EBCTCG meta-analysis demonstrated that 5 years of tamoxifen was superior to shorter durations. The following results were reported:[21]
  - A highly significant advantage of 5 years versus 1 to 2 years of tamoxifen with respect to the risk of recurrence (proportionate reduction, 15.2%; P < .001) and a less significant advantage with respect to mortality (proportionate reduction, 7.9%; P = .01) was observed.
2. Long-term follow-up of the Adjuvant Tamoxifen Longer Against Shorter (ATLAS (https://www.cancer.gov/clinicaltrials/NCT00003016) [NCT00003016]) trial demonstrated that 10 years of tamoxifen therapy was superior to 5 years of tamoxifen therapy. Between 1996 and 2005, 12,894 women with early breast cancer were randomly assigned to receive 10 years or 5 years of tamoxifen therapy. The following results were reported:[43][Level of evidence A1]
  a. Study results revealed that 10 years of tamoxifen reduced the risk of breast cancer recurrence (617 recurrences for 10 years of tamoxifen vs. 711 recurrences for 5 years of tamoxifen; P = .002), reduced breast cancer mortality (331 deaths for 10 years of tamoxifen vs. 397 deaths for 5 years of tamoxifen; P = .01), and reduced overall mortality (639 deaths for 10 years of tamoxifen vs. 722 deaths for 5 years of tamoxifen; P = .01).
  b. Of note, from the time of the original breast cancer diagnosis, the benefits of 10 years of therapy were less extreme before than after year 10. At 15 years from the time of diagnosis, breast cancer mortality was 15% at 10 years and 12.2% at 5 years.
  c. Compared with 5 years, 10 years of tamoxifen therapy increased the risk of the following:
    - Pulmonary embolus: RR, 1.87 (95% CI, 1.13–3.07; P = .01).
    - Stroke: RR, 1.06 (95% CI, 0.83–1.36).
    - Ischemic heart disease: RR, 0.76 (95% CI, 0.6–0.95; P = .02).
    - Endometrial cancer: RR, 1.74 (95% CI, 1.30–2.34; P = .0002). Notably, the cumulative risk of endometrial cancer during years 5 to 14 from breast cancer diagnosis was 3.1% for women who received 10 years of tamoxifen versus 1.6% for women who received 5 years of tamoxifen. The mortality for years 5 to 14 was 12.2 versus 15 for an absolute mortality reduction of 2.8%.
  The results of the ATLAS trial indicated that for women who remained premenopausal after 5 years of adjuvant tamoxifen, continued tamoxifen for 5 more years was beneficial.[43] Women who have become menopausal after 5 years of tamoxifen may also be treated with AIs. For more information, see the Aromatase inhibitors section.

##### Tamoxifen and chemotherapy

Because of the results of an EBCTCG analysis, the use of tamoxifen in women who received adjuvant chemotherapy does not attenuate the benefit of chemotherapy.[21] However, concurrent use of tamoxifen with chemotherapy is less effective than sequential administration.[44]

#### Ovarian ablation, tamoxifen, and chemotherapy

Evidence suggests ovarian ablation alone is not an effective substitute for other systemic therapies.[45-49] Further, the addition of ovarian ablation to chemotherapy and/or tamoxifen has not been found to significantly improve outcomes.[47,49-52]

Evidence (tamoxifen plus ovarian suppression):

1. The largest study (SOFT (https://www.cancer.gov/clinicaltrials/NCT00066690) [NCT00066690]) to examine the addition of ovarian ablation to tamoxifen with or without chemotherapy randomly assigned 2,033 premenopausal women (53% of whom had received previous chemotherapy) to receive tamoxifen or tamoxifen plus ovarian suppression with triptorelin or ablation with surgery or radiation therapy.[53][Level of evidence B1]
  - Upon initial report, with a median follow-up of 5.6 years, there was no significant difference in the primary outcome of DFS (HR, 0.83; 95% CI, 0.66–1.04; P = .10); the 5-year DFS rate was 86% in the tamoxifen-plus-ovarian-suppression group versus 84.7% in the tamoxifen-alone group. However, updated results with a median follow-up of 8 years, demonstrated improved DFS with tamoxifen plus ovarian suppression compared with tamoxifen alone (HR, 0.76; 95% CI, 0.62–0.93; P = .009); the 8-year DFS rate was 83.2% in the tamoxifen-plus-ovarian-suppression group versus 78.9% in the tamoxifen-alone group.
  - In addition, OS at 8 years was improved with tamoxifen plus ovarian suppression compared with tamoxifen alone (HR, 0.67; 95% CI, 0.48–0.92; P = .01); the 8-year OS rate was 93.3% in the tamoxifen-plus-ovarian-suppression group versus 91.5% in the tamoxifen-alone group.
    Despite overall negative initial results, subgroup analysis suggested a benefit with ovarian suppression in women who underwent chemotherapy and remained premenopausal afterwards. Follow-up results at 8 years, however, did not demonstrate heterogeneity of treatment effect according to whether chemotherapy was administered, although recurrences were more frequent among patients who received chemotherapy.[54]
2. A Korean Breast Cancer Study Group trial (NCT00912548 (https://www.cancer.gov/clinicaltrials/NCT00912548)) included 1,293 premenopausal women younger than 45 years, all of whom had received adjuvant chemotherapy and either retained ovarian function or regained it after 2 years of tamoxifen. Patients were randomly assigned to receive either ovarian function suppression with goserelin plus tamoxifen or tamoxifen alone.[55]
  - In the intent-to-treat analysis of 1,282 patients, the 5-year DFS rate was 89.8% for patients in the goserelin-plus-tamoxifen group and 87.3% for patients in the tamoxifen-alone group (HR, 0.69; 95% CI, 0.49–0.98; P = .036).
  - OS was a secondary end point and was also improved for patients in the goserelin-plus-tamoxifen group (HR, 0.31; 95% CI, 0.10–0.95; P = .039).[55][Level of evidence A1]

#### Aromatase inhibitors

##### Premenopausal women

AIs have been compared with tamoxifen in premenopausal women in whom ovarian function was suppressed or ablated. The results of these studies have been conflicting.

Evidence (comparison of an AI with tamoxifen in premenopausal women):

1. In one study (NCT00295646 (https://www.cancer.gov/clinicaltrials/NCT00295646)), 1,803 women who received goserelin were randomly assigned to a 2 × 2 factorial design trial that compared anastrozole and tamoxifen, with or without zoledronic acid.[56]
  - At a median follow-up of 62 months, there was no difference in DFS (HR, 1.08; 95% CI, 0.81–1.44; P = .59).
  - OS was superior with tamoxifen (HR, 1.75; 95% CI, 1.08–2.83; P = .02).
2. In two unblinded studies that were analyzed together (TEXT (https://www.cancer.gov/clinicaltrials/NCT00066703) [NCT00066703] and SOFT (https://www.cancer.gov/clinicaltrials/NCT00066690) [NCT00066690]), exemestane was also compared with tamoxifen in 4,690 premenopausal women who underwent ovarian ablation.[57]
  a. The use of exemestane resulted in a significant difference in DFS. The 8-year DFS rate was 86.8% in the exemestane-ovarian suppression group vs. 82.8% in the tamoxifen-ovarian suppression group (HR, 0.77; 95% CI, 0.67–0.90; P < .001).[57][Level of evidence B1]
  b. The 8-year rate of freedom from distant recurrence was also higher in the exemestane-ovarian suppression group (91.8% vs. 89.7%; HR, 0.80; 95% CI, 0.66–0.96; P = .02).
  c. Despite improvements in DFS and freedom from distant recurrence, no difference in OS was observed in the exemestane-ovarian suppression group compared with the tamoxifen-ovarian suppression group (93.4% vs. 93.3%; HR, 0.98; 95% CI, 0.79–1.22; P = .84).[57][Level of evidence A1] However, after a median follow-up of 12 years in the SOFT trial, the 12-year OS rate was 89.4% in the exemestane-ovarian suppression group and 86.8% in a tamoxifen-alone group from that study (HR, 0.80; 95% CI, 0.62–1.04).[58]
  d. A follow-up report on the differences in quality of life (QOL) for the exemestane-ovarian suppression group versus the tamoxifen-ovarian suppression group observed the following results (the differences cited below were all significant at P < .001 and occurred in patients who did and did not receive chemotherapy):[59]
    - Patients who received tamoxifen plus ovarian function suppression were more affected by hot flashes and sweats over 5 years than were those who received exemestane plus ovarian function suppression, although these symptoms improved.
    - Patients who received exemestane plus ovarian function suppression reported more vaginal dryness, greater loss of sexual interest, and more difficulties becoming aroused than did patients who received tamoxifen plus ovarian function suppression. These differences persisted over time.
    - An increase in bone or joint pain was more pronounced, particularly in the short term, in patients who received exemestane plus ovarian function suppression than in patients who received tamoxifen plus ovarian function suppression.
    - Changes in global QOL indicators from baseline were small and similar between treatments over the 5 years.[59][Level of evidence A3]

##### Postmenopausal women

In postmenopausal women, the use of AIs in sequence with or as a substitute for tamoxifen has been the subject of multiple studies, the results of which have been summarized in an individual patient-level meta-analysis.[60]

###### Initial therapy

Evidence (AI vs. tamoxifen as initial therapy in postmenopausal women):

1. A large randomized trial of 9,366 patients compared the use of the AI anastrozole and the combination of anastrozole and tamoxifen with tamoxifen alone as adjuvant therapy for postmenopausal patients with lymph node–negative or lymph node–positive disease. Most (84%) of the patients in the study were hormone receptor–positive. Slightly more than 20% had received chemotherapy.[61]; [62][Level of evidence B1]
  - With a median follow-up of 33.3 months, no benefit in DFS was observed for the combination arm relative to tamoxifen alone.[61]
  - Patients on anastrozole, however, had a significantly longer DFS (HR, 0.83) than those on tamoxifen. In an analysis conducted after a median follow-up of 100 months among hormone receptor–positive patients, DFS was significantly (P = .003) longer in patients on anastrozole (HR, 0.85; 95% CI, 0.76–0.94), but OS was not improved (HR, 0.97; 95% CI, 0.86–1.11; P = .7).[62]
  - Patients on tamoxifen more frequently developed endometrial cancer and cerebrovascular accidents, whereas patients on anastrozole had more fracture episodes. The frequency of myocardial infarction was similar in both groups. Except for a continued increased frequency of endometrial cancer in the tamoxifen group, these differences did not persist in the posttreatment period.[62]
2. A large, double-blind, randomized trial of 8,010 postmenopausal women with hormone receptor–positive breast cancer compared the use of letrozole with tamoxifen given continuously for 5 years or with crossover to the alternate drug at 2 years.[63] An updated analysis from the International Breast Cancer Study Group (IBCSG-1-98 (https://www.cancer.gov/clinicaltrials/NCT00004205) [NCT00004205]) reported results on the 4,922 women who received tamoxifen or letrozole for 5 years at a median follow-up of 51 months.[64][Level of evidence B1]
  - DFS was significantly superior in patients treated with letrozole (HR, 0.82; 95% CI, 0.71–0.95; P = .007; 5-year DFS, 84.0% vs. 81.1%).
  - OS was not significantly different in patients treated with letrozole (HR, 0.91; 95% CI, 0.75–1.11; P = .35).
3. In a meta-analysis, which included 9,885 women from multiple trials, the 10-year recurrence risk was 19.1% in the AI group versus 22.7% in the tamoxifen group (RR, 0.80; 95% CI, 0.73–0.88; P < .001). The overall 10-year mortality rate was also reduced from 24.0% to 21.3%. (RR, 0.89; 95% CI, 0.8–0.97; P = .01).[60][Level of evidence A2]

##### Sequential tamoxifen and AI versus 5 years of tamoxifen

Several trials and meta-analyses have examined the effect of switching to anastrozole or exemestane to complete a total of 5 years of therapy after 2 to 3 years of tamoxifen.[65-67] The evidence, as described below, indicates that sequential tamoxifen and AI is superior to remaining on tamoxifen for 5 years.

Evidence (sequential tamoxifen and AI vs. 5 years of tamoxifen):

1. Two trials carried out in sequence by the same group enrolled a total of 828 patients and were reported together; one trial used aminoglutethimide as the AI, and the other trial used anastrozole.[67]
  - After a median follow-up of 78 months, an improvement in all-cause mortality (HR, 0.61; 95% CI, 0.42–0.88; P = .007) was observed in the AI groups.[67][Level of evidence A1]
2. Two other trials were reported together.[66] A total of 3,224 patients were randomly assigned after 2 years of tamoxifen to continue tamoxifen for a total of 5 years or to take anastrozole for 3 years.[67]
  - There was a significant difference in EFS (HR, 0.80; 95% CI; P = .0009), but not in OS (5-year OS, 97% CI for the switched arm vs. 96% CI for the tamoxifen-alone arm; P = .16).[67][Level of evidence B1]
3. A large, double-blind, randomized trial (EORTC-10967 (https://www.cancer.gov/clinicaltrials/NCT00003418) [ICCG-96OEXE031-C1396-BIG9702]) (NCT00003418) of 4,742 patients compared continuing tamoxifen with switching to exemestane for a total of 5 years of therapy in women who had received 2 to 3 years of tamoxifen.[68][Level of evidence B1]
  - After the second planned interim analysis, when median follow-up for patients on the study was 30.6 months, the results were released because of a highly significant (P < .005) difference in DFS (HR, 0.68) favoring the exemestane arm.[68]
  - After a median follow-up of 55.7 months, the HR for DFS was 0.76 (95% CI, 0.66–0.88; P = .001) in favor of exemestane.[69][Level of evidence A1]
  - At 2.5 years after random assignment, 3.3% fewer patients on exemestane had developed a DFS event (95% CI, 1.6–4.9). The HR for OS was 0.85 (95% CI, 0.7–1.02; P = .08).[69]
4. In a meta-analysis, which included 11,798 patients from six trials, the 10-year recurrence rate was reduced from 19% to 17% in the AI-containing groups (RR, 0.82; 95% CI, 0.75–0.91; P = .0001). The 10-year overall mortality rate was 17.5% in the tamoxifen group and 14.6% in the AI-containing group (RR, 0.82; 95% CI, 0.73–0.91; P = .0002).[60][Level of evidence A2]

##### Sequential tamoxifen and AI for 5 years versus an AI for 5 years

The evidence indicates that there is no benefit to the sequential use of tamoxifen and an AI for 5 years over 5 years of an AI.

Evidence (sequential tamoxifen and AI vs. an AI for 5 years):

1. A large, randomized trial of 9,779 patients compared DFS of postmenopausal women with hormone receptor–positive breast cancer between initial treatment with sequential tamoxifen for 2.5 to 3 years followed by exemestane for a total of 5 years versus exemestane alone for 5 years. The primary end points were DFS at 2.75 years and 5.0 years.[70][Level of evidence B1]
  - The 5-year DFS rate was 85% in the sequential group and 86% in the exemestane-alone group (HR, 0.97; 95% CI, 0.88–1.08; P = .60).
2. Similarly in the IBCSG 1-98 (https://www.cancer.gov/clinicaltrials/NCT00004205) trial (NCT00004205), two sequential arms were compared with 5 years of letrozole.[71][Level of evidence B1]
  - There was no difference in DFS when the two sequential arms were compared with 5 years of letrozole (letrozole to tamoxifen HR, 1.06; 95% CI, 0.91–1.23; P = .45 and tamoxifen to letrozole HR, 1.07; 95% CI, 0.92–1.25; P = .36).
3. The FATA-GIM3 (https://www.cancer.gov/clinicaltrials/NCT00541086) trial (NCT00541086), which was not included in the meta-analysis, compared 2 years of tamoxifen followed by 3 years of one of the three AIs with 5 years of an AI.[72]
  - No significant difference in the 5-year DFS rate was found between the two approaches (88.5% for switching; 89.8% for upfront AI; HR, 0.89; 95% CI, 0.73–1.08; P = .23).
4. In a meta-analysis, which included 12,779 patients from the trials, the 7-year recurrence rate was slightly reduced from 14.5% to 13.8% in the groups that received 5 years of an AI (RR, 0.90; 95% CI, 0.81–0.99; P = .045). The overall mortality rate at 7 years was 9.3% in the tamoxifen-followed-by-AI groups and 8.2% in the AI-alone groups (RR, 0.89; 95% CI, 0.78–1.03; P = .11).[60][Level of evidence A2]

##### One AI versus another for 5 years

1. The mild androgen activity of exemestane prompted a randomized trial that evaluated whether exemestane might be preferable to anastrozole, in terms of its efficacy (i.e., EFS) and toxicity, as upfront therapy for postmenopausal women diagnosed with hormone receptor–positive breast cancer.[73][Level of evidence A1] The MA27 (https://www.cancer.gov/clinicaltrials/NCT00066573) trial (NCT00066573) randomly assigned 7,576 postmenopausal women to receive 5 years of anastrozole or exemestane.
  - At a median follow-up of 4.1 years, no difference in efficacy was seen (HR, 1.02; 95% CI, 0.87–1.18; P = .86).[73][Level of evidence B1]
  - The two therapies also were not significantly different in terms of impact on bone mineral density or fracture rates.[74][Level of evidence B1]
2. In the Femara Versus Anastrozole Clinical Evaluation (FACE (https://www.cancer.gov/clinicaltrials/NCT00248170)) study (NCT00248170), 4,136 patients with hormone receptor–positive disease were randomly assigned to receive either letrozole or anastrozole.[75]
  - There was no significant difference in DFS (HR, 0.93; 95% CI, 0.80–1.07; P = .3150) at the time of a final analysis that was conducted when there were 709 of the planned 959 events.
  - There were no substantial differences in adverse events between the arms.
3. In the FATA-GIM3 (https://www.cancer.gov/clinicaltrials/NCT00541086) trial, 3,697 patients with hormone receptor–positive disease were randomly assigned among the three AIs either for 5 years or after 2 years of tamoxifen.[72]
  - No significant difference in 5-year DFS (90.0% for anastrozole, 88.0% for exemestane, and 89.4% for letrozole; P = .24) was noted among the three AIs.

##### Switching to an AI after 5 years of tamoxifen

The evidence, as described below, indicates that switching to an AI after 5 years of tamoxifen is superior to stopping tamoxifen at that time.

1. A large, double-blinded, randomized trial (CAN-NCIC-MA17 (https://www.cancer.gov/clinicaltrials/NCT00003140) [NCT00003140]) of 5,187 patients compared the use of letrozole versus placebo in receptor-positive postmenopausal women who received tamoxifen for approximately 5 years (range, 4.5–6.0) years.[76][Level of evidence B1]
  - After the first planned interim analysis, when median follow-up for patients in the study was 2.4 years, the results were unblinded because of a highly significant (P < .008) difference in DFS (HR, 0.57), favoring the letrozole arm.[76]
  - After 3 years of follow-up, 4.8% of the women on the letrozole arm had developed recurrent disease or new primaries versus 9.8% on the placebo arm (95% CI for the difference, 2.7%–7.3%). Because of the early unblinding of the study, longer-term comparative data on the risks and benefits of letrozole in this setting will not be available.[77,78]
  - An updated analysis including all events before unblinding confirmed the results of the interim analysis.[79] In addition, a statistically significant improvement in distant DFS was found for patients who received letrozole (HR, 0.60; 95% CI, 0.43–0.84; P = .002). Although no statistically significant difference was found in the total study population, the lymph node-positive patients who received letrozole also experienced a statistically significant improvement in OS (HR, 0.61; 95% CI, 0.38–0.98; P = .04), although the P value was not corrected for multiple comparisons.
2. The NSABP B-33 (https://www.cancer.gov/clinicaltrials/NCT00016432) trial (NCT00016432) that was designed to compare 5 years of exemestane with placebo after 5 years of tamoxifen was stopped prematurely when the results of CAN-NCIC-MA17 (https://www.cancer.gov/clinicaltrials/NCT00003140) became available. At the time of analysis, 560 of the 783 patients who were randomly assigned to receive exemestane remained on that drug and 344 of the 779 patients who were randomly assigned to receive placebo had crossed over to exemestane.[80][Level of evidence B1]
  - An intent-to-treat analysis of the primary study end point, DFS, demonstrated a nonsignificant benefit of exemestane (HR, 0.68; P = .07).

##### Duration of AI therapy

The optimal duration of AI therapy is uncertain, and multiple trials have evaluated courses longer than 5 years.

Evidence regarding extension of endocrine therapy beyond 5 years of initial AI-based adjuvant therapy:

1. A double-blind, randomized, phase III trial assessed the effect of an additional 5 years of letrozole versus placebo in 1,918 women who had received 5 years of an AI.[81] Patients who received previous tamoxifen therapy were included. Most women on the study (70.6%) had received 4.5 to 6 years of adjuvant tamoxifen, but a significant proportion of them (20.7%) had been treated initially with an AI. The primary study end point was DFS.
  a. At a median follow-up of 6.3 years, DFS was significantly improved in patients randomly assigned to receive letrozole (HR, 0.66; 95% CI, 0.48–0.91; P = .01). The 5-year DFS rate was improved from 91% to 95%.[81][Level of evidence B1]
  b. OS rates showed no difference (HR, 0.97; 95% CI, 0.73–1.28; P = .83). More patients who received letrozole had fractures (14%) than did patients who received placebo (9%) (P = .001).
  c. QOL was assessed with the Medical Outcomes Study 36-Item Short-Form Health Survey (SF-36) and Menopause-Specific QOL (MENQOL) instruments. More than 85% of participants completed yearly assessments over a 5-year period.
    - No between-group differences were found on the four MENQOL subscales or on the SF-36 summary score.
    - SF-36 role-emotional and bodily pain scores were statistically significantly worse (P = .03) among patients receiving letrozole, but the differences observed were fewer than the minimum clinically important differences for the SF-36 instrument.
2. A randomized phase III study assessed the effect of an additional 2.5 years of letrozole versus 5 years of letrozole in 1,824 women who received 5 years of an AI.[Level of evidence B1] [82]
  - DFS events were similar in both groups (HR, 0.92; 95% CI, 0.74–1.16). The distant metastasis-free interval was also similar (HR, 1.06; 95% CI, 0.78–1.45).
  - A subgroup analysis did not identify patients who benefited from 5-year extended therapy.
  - This study did not show that 10 years of AI therapy was superior to 7.5 years of AI therapy.
3. A phase III trial (NSABP-B42 (https://www.cancer.gov/clinicaltrials/NCT00382070) [NCT00382070]) randomly assigned, in a double-blind fashion, 3,966 women who received 5 years of initial adjuvant therapy with an AI or received tamoxifen for 2 to 3 years followed by an AI to receive 5 mg of letrozole or placebo for 5 additional years.[83][Level of evidence B1] The planned analysis of DFS was carried out after a median follow-up of 6.9 years.
  - The 7-year DFS rate was 81.3% in the placebo group and 84.7% in the letrozole group (HR, 0.85; 95% CI, 0.73–0.999; P = .048). The observed difference was not statistically significant when interim analyses were accounted for.
  - There were no statistically significant differences in adverse events between the arms.
4. A phase III trial conducted by the IBCSG (SOLE (https://www.cancer.gov/clinicaltrials/NCT00553410) [NCT00553410]) included 4,851 receptor-positive postmenopausal women who had completed 5 years of adjuvant therapy with an AI, a selective estrogen receptor (ER) modulator, or both. Patients were randomly assigned to receive 2.5 mg of letrozole daily for 5 years or to an intermittent schedule in which there was a 3-month break at the end of each of the first 4 years, but not in the final year.[84]
  - There was no observed advantage to the intermittent schedule with respect to DFS (HR, 1.08; 95% CI, 0.93–1.26; P = .31) or in the frequency of adverse events.[84][Level of evidence B1]
5. A phase III trial conducted by the Dutch Breast Cancer Study Group (DATA (https://www.cancer.gov/clinicaltrials/NCT00301457) [NCT00301457]) randomly assigned 1,860 eligible receptor-positive postmenopausal women who had received 2 to 3 years of tamoxifen to receive either 3 or 6 years of anastrozole (1 mg daily).[85]
  - At 3 years, 1,660 of these women were free of disease: among them, DFS was observed to be improved, but not statistically significantly so, on the extended-therapy arm (HR, 0.79; 95% CI, 0.62–1.02).[85][Level of evidence B1] Myalgia and osteoporosis/osteopenia were more frequent on the extended-therapy arm.
6. A phase III, open-label, Italian trial (NCT01064635 (https://www.cancer.gov/clinicaltrials/NCT01064635)) included 2,056 hormone receptor–positive postmenopausal women who had received 2 to 3 years of tamoxifen treatment. Patients were randomly assigned to receive letrozole for either 2 to 3 years (control) or 5 years (extended therapy). The primary end point was IDFS.[86]
  - After 11.7 years of follow-up, the 12-year DFS rate was 62% in the control group and 67% in the extended-therapy group (HR, 0.78; 95% CI, 0.65–0.93; P = .0064). These results were confirmed in a landmark analysis that excluded patients who experienced a DFS event or who were lost to follow-up before treatment divergence (2–3 years after randomization).
  - The 12-year OS rate was 84% in the control group and 88% in the extended-therapy group (HR, 0.77; 95% CI, 0.60–0.98; P = .036).[86][Level of evidence A1]
  - Grade 3 or greater arthralgia and myalgia were slightly more frequent in the extended-therapy group than in the control group (3.0% vs. 2.2% and 0.9% vs. 0.7%, respectively).
7. The phase III ABCSG-16 study enrolled 3,484 postmenopausal women with hormone receptor–positive breast cancer who had completed 5 years of endocrine therapy with tamoxifen and/or an AI to either 2 or 5 years of extended therapy with anastrozole. The primary end point was DFS in the 3,208 patients who remained in the study after 2 years. Secondary end points included OS, time to contralateral breast cancer, time to second primary cancer, fractures, and toxicity.[87]
  - After 10 years of follow-up, there was no difference in DFS between the two arms (73.6% for the 2-year course vs. 73.9% for the 5-year course [HR, 0.99; 95% CI, 0.85–1.15; P = .90]). In addition, there was no difference in OS, time to second primary cancer, and time to contralateral breast cancer between the arms.[87][Level of evidence B1]
  - There was a trend toward more fractures in the 5-year arm (4.7% vs. 6.3%; HR, 1.35; 95% CI, 1.00–1.84).
8. An open-label trial in Japan included 1,697 patients who had received either (1) 5 years of anastrozole or (2) 2 to 3 years of tamoxifen, followed by 2 to 3 years of anastrozole. Patients were randomly assigned to either discontinue anastrozole or continue it for 5 years. The primary end point was DFS.[88]
  - In an analysis done after all patients had completed protocol therapy, DFS was improved in the continued-therapy group (5-year DFS rate, 91% vs. 86%; HR, 0.62; 95% CI, 0.46–0.83; P < .0010).[88][Level of evidence B1]
  - There was no difference in distant DFS or OS.

#### Endocrine therapy and cyclin-dependent kinase (CDK) inhibitor therapy

CDK4 and CDK6 have been implicated in the continued proliferation of hormone receptor–positive breast cancer that is resistant to endocrine therapy. CDK inhibitors, in combination with endocrine therapy, have been approved by the FDA in both first-line and later-line treatment of patients with advanced, HER2-negative, hormone receptor–positive breast cancer and are now being studied in the adjuvant setting. Abemaciclib is currently the only FDA-approved CDK inhibitor in the adjuvant setting.

Evidence (CDK inhibitors in the adjuvant setting):

1. The monarchE (https://www.cancer.gov/clinicaltrials/NCT03155997) trial (NCT03155997) examined the effect of adding abemaciclib to standard endocrine therapy in women with HER2-negative hormone receptor–positive breast cancer who were at high risk of recurrence.[89] The trial enrolled 5,637 women who met one of the following criteria: four or more positive nodes; or one to three positive nodes and either tumor size 5 cm or larger, histological grade 3, or central Ki67 20% or greater. The women were randomly assigned in a 1:1 ratio to standard-of-care adjuvant endocrine therapy with or without open-label abemaciclib (150 mg twice daily for 2 years). The primary end point was IDFS and secondary end points included DRFS, OS, and safety.
  - At a median follow-up of 54 months, an analysis showed that adding abemaciclib resulted in a substantial improvement in IDFS (5-year IDFS: 76% vs. 83.6%; HR, 0.680; 95% CI, 0.599–0.772; P < .001) and DRFS (5-year DRFS: 79.2% vs. 86%; HR, 0.675; 95% CI, 0.588–0.774; P < .001).
  - There were 208 deaths in the abemaciclib arm and 234 deaths in the endocrine therapy-alone arm. This difference was not statistically significant.[90][Level of evidence B1]
  - Because of adverse events, abemaciclib dose adjustments occurred in 1,901 patients (68.1%); 56.9% of these patients had dose omissions and 41.2% had dose reductions. In the abemaciclib arm, 463 patients (16.6%) discontinued abemaciclib because of adverse events, 306 of whom remained on endocrine therapy.[89]
  - Similar results were found in a prespecified subgroup analysis of patients who had received neoadjuvant chemotherapy and had residual disease after surgery.[91]
2. The NATALEE (https://www.cancer.gov/clinicaltrials/NCT03701334) trial (NCT03701334) evaluated adding ribociclib to standard adjuvant therapy in women and men with stage II to stage III HER2-negative hormone receptor–positive breast cancer.[92] A total of 5,101 patients were randomly assigned without blinding to receive either a nonsteroidal AI alone or in combination with ribociclib within 12 months of starting a nonsteroidal AI. The primary end point was IDFS.
  - At the time of the second planned interim analysis, when the median duration of follow-up was 28 months, there was a significant difference in IDFS favoring the ribociclib arm (3-year IDFS, 90.4% for ribociclib plus nonsteroidal AI vs 87.1% for nonsteroidal AI alone) (HR, 0.75; 95% CI, 0.62–0.91; P = .003). This P-value exceeded the prespecified cutoff of .0256.[92][Level of evidence B1]
  - The exploratory end points of distant DFS, RFS, DRFS, and OS favored the ribociclib arm, but the differences were not formally tested for significance in this analysis.
  - Neutropenia (62.15% vs. 4.5%) and liver-related events (25.4% vs. 10.6%) were more common in the ribociclib-plus-nonsteroidal AI group than the nonsteroidal AI-alone group. A total of 477 patients discontinued ribociclib, and 554 patients had dose reductions. There were no treatment-related deaths.
3. The PALLAS (https://www.cancer.gov/clinicaltrials/NCT02513394) trial (NCT02513394) studied the effect of adding palbociclib to standard adjuvant therapy in women with stage II to stage III HER2-negative hormone receptor–positive breast cancer.[93] In the trial, 5,760 women who were within 6 months of initiating adjuvant endocrine therapy were randomly assigned in a 1:1 ratio without blinding to receive palbociclib plus endocrine therapy or to continue endocrine therapy alone. The primary end point was IDFS.
  - At the time of the second interim analysis, no significant difference between the treatment arms was found (HR, 0.93; 95% CI, 0.76–1.15; 3-year IDFS rates, 88.2% vs. 88.5%; P = .51).[93][Level of evidence B1] The planned final analysis yielded similar results.[94]
  - As the test statistic for futility crossed the prespecified boundary, the data safety monitoring committee recommended that patients discontinue palbociclib therapy.
  - Neutropenia and leukopenia were much more common in patients on the palbociclib arm, and fatigue was slightly more common. There were no treatment-related deaths.

### Bone-Modifying Therapy for Stages I, II, and III Breast Cancer

Both bisphosphonates and denosumab have been evaluated as adjuvant therapies for early-stage breast cancer; however, their role is unclear. Compared with denosumab, the amount of evidence supporting bisphosphonates is greater, and there is evidence supporting a reduction in breast cancer mortality—an end point that is more clinically relevant. The optimal duration of bisphosphonate therapy is uncertain.

Evidence (bisphosphonates in the treatment of early breast cancer):

1. A meta-analysis included data from 18,766 patients from 26 adjuvant trials of bisphosphonates of any type.[95] Overall, reductions associated with bisphosphonate use in recurrence (RR, 0.94; 95% CI, 0.87–1.01; 2-sided P = .08), distant recurrence (RR, 0.92; 95% CI, 0.85–0.99; 2-sided P = .03), and breast cancer mortality (RR, 0.91; 95% CI, 0.83–0.99; 2-sided P = .04) were of only borderline significance, but the reduction in bone recurrence was more definite (RR, 0.83; 95% CI, 0.73–0.94; 2-sided P = .004).
  - In a prespecified subgroup analysis among premenopausal women, treatment had no apparent effect on any outcome, but among 11,767 postmenopausal women, it produced highly significant reductions in recurrence (RR, 0.86; 95% CI, 0.78–0.94; 2-sided P = .002), distant recurrence (RR, 0.82; 95% CI, 0.74–0.92; 2-sided P = .0003), bone recurrence (RR, 0.72; 95% CI, 0.60–0.86; 2-sided P = .0002), and breast cancer mortality (RR, 0.82; 95% CI, 0.73–0.93; 2-sided P = .002).[95]
2. The ABCSG-18 (https://www.cancer.gov/clinicaltrials/NCT00556374) trial (NCT00556374) included 3,435 postmenopausal women with receptor-positive breast cancer who were receiving an AI. Patients were randomly assigned to receive denosumab or a placebo every 6 months during AI therapy.[96] The patients were unblinded when results related to bone events were reported, and patients on placebo were allowed to cross over to the active drug.
  - In an intent-to-treat analysis according to the original assignment, DFS, a secondary end point, was improved in patients who received denosumab (5-year DFS rate, 89.2% vs. 87.3%; HR, 0.82; 95% CI, 0.69–0.98; P = .0260).[96][Level of evidence B1]
  - The frequency of adverse events was similar in the two groups.
3. The D-CARE (https://www.cancer.gov/clinicaltrials/NCT01077154) trial (NCT01077154) randomly assigned 4,509 women with stage II or stage III breast cancer to receive denosumab or placebo.[97]
  - The primary end point of bone metastasis–free survival was not significantly different between the groups (median, not reached in either group; HR, 0.97; 95% CI, 0.82−1.14; P = .70).[97][Level of evidence B1]
4. The SUCCESS (https://www.cancer.gov/clinicaltrials/NCT02181101) trial (NCT02181101) included 3,421 patients with node-positive or high-risk (≥pT2, grade 3, hormone receptor–negative, or aged 35 years or younger) node-negative breast cancer who completed adjuvant chemotherapy. Patients were randomly assigned to receive zoledronate 4 mg intravenously (IV) for either 2 years (every 3 months) or 5 years (every 3 months for 2 years and then every 6 months for 3 years). Only those patients who completed 2 years of zoledronate treatment (1,447 on the 2-year arm; 1,729 on the 5-year arm) were included in the final analysis. The main study end points were DFS and OS.[98]
  - Outcomes were similar between the two arms for DFS (HR, 0.97; 95% CI, 0.76–1.25; P = .83) and OS (HR, 0.93; 95% CI, 0.65–1.34; P = .71).[98][Level of evidence A1]
  - An accompanying editorial explained why the results of this study do not definitively establish how long bisphosphonates should be administered.[99]

### Adjuvant PARP Inhibitors for Patients with Germline BRCA1 and BRCA2 Variants

The role of adjuvant poly (ADP-ribose) polymerase (PARP) inhibition has been evaluated in patients with early-onset breast cancer and germline BRCA1 or BRCA2 pathogenic variants. BRCA1 and BRCA2 are tumor suppressor genes that encode proteins involved in DNA repair (via the homologous recombination repair pathway). PARP plays a critical role in DNA repair.

Evidence (olaparib):

1. The OlympiA (https://www.cancer.gov/clinicaltrials/NCT02032823) trial (NCT02032823) randomly assigned 1,836 patients with HER2-negative breast cancer and germline BRCA1 or BRCA2 pathogenic variants to receive either 1 year of adjuvant olaparib (300 mg twice daily) or placebo. All women completed surgery and adjuvant or neoadjuvant chemotherapy or radiation therapy. Patients were considered at higher risk of recurrence on the basis of tumor size, node involvement, or the presence of residual cancer after neoadjuvant therapy.[100]
  Eligibility criteria for patients who underwent initial surgery and received adjuvant chemotherapy
  - Patients with triple-negative breast cancer (TNBC) had axillary node-positive (≥pN1, any tumor size) disease OR axillary node-negative disease with an invasive primary tumor larger than 2 cm (pN0, ≥pT2).
  - At least four pathologically confirmed positive lymph nodes were required for ER- and/or PR-positive/HER2-negative patients.
  Eligibility criteria for patients who underwent neoadjuvant chemotherapy followed by surgery
  - Patients with TNBC had residual invasive cancer in the breast and/or resected lymph nodes (i.e., no pCR).
  - ER- and/or PR-positive/HER2-negative patients had residual invasive cancer in the breast and/or resected lymph nodes (i.e., no pCR) AND a CPS+EG (Clinical stage/Pathological Stage + ER status/nuclear Grade) score of 3 or higher.[101]
  The primary study end point was invasive disease-free survival (IDFS).[100][Level of evidence B1]
  a. At the time of the first (and only) planned interim analysis, when 284 events (i.e., invasive disease or death) had occurred, the HR for IDFS strongly favored the olaparib arm, and the prespecified stopping boundary for significance was exceeded (3-year IDFS rate, 85.9% vs 77.1%; HR, 0.58; 99.5% CI, 0.41–0.82; P < .001).[100][Level of evidence B1]
  b. Distant DFS was also statistically significantly improved for patients who received olaparib (HR, 0.57; 99.5% CI, 0.39–0.83; P < .001).
  c. A difference in OS was also observed (HR, 0.68; 99% CI, 0.44–1.05; P = .02), but it did not meet the prespecified level of significance when corrected for multiple testing (P < .01).
  d. Grade 3 or higher adverse events that occurred in more than 1% of patients on the olaparib arm included anemia (8.7%), decreased neutrophil count (4.8%), decreased white cell count (3.0%), fatigue (1.8%), and lymphopenia (1.2%). No adverse events of grade 3 or higher occurred in more than 1% of the patients on the placebo arm.
  e. Patient-reported outcomes were assessed among the 1,538 patients who completed both a baseline questionnaire and at least one subsequent questionnaire.[102]
    - Patients who received olaparib experienced statistically significant greater fatigue than patients who received placebo, but the differences did not meet the criteria for clinical significance. The fatigue resolved over time after cessation of therapy.
    - Patients who received olaparib had small but statistically and clinically significant increases in nausea, vomiting, and appetite loss scores during treatment.[102][Level of evidence A3]

### Stages I, II, and III Triple-Negative Breast Cancer (TNBC)

TNBC is defined as the absence of staining for ER, PR, and HER2. TNBC is insensitive to some of the most effective therapies for patients with breast cancer, including HER2-directed therapy such as trastuzumab and endocrine therapies such as tamoxifen or AIs.

#### Preoperative therapy for TNBC

Patients with TNBC are frequently treated with preoperative systemic therapy.

##### Chemotherapy

Promising results have been observed with the addition of carboplatin to anthracycline/taxane combination chemotherapy regimens in patients with TNBC.

Evidence (adding carboplatin to an anthracycline/taxane–based chemotherapy regimen in patients with TNBC):

1. In the GeparSixto (https://www.cancer.gov/clinicaltrials/NCT01426880) trial (NCT01426880), carboplatin was added to an anthracycline/taxane–based backbone.[103][Level of evidence B3]
  - Higher pCR rates were observed with the addition of carboplatin to an anthracycline/taxane–based backbone compared with anthracycline/taxane alone (36.9% vs. 53.2%; P = .005) in patients with TNBC.
  - Patients with BRCA1 or BRCA2 variants had a higher rate of pCR, which was not increased by the addition of carboplatin (66.7% in the nonplatinum arm vs. 65.7% in the platinum-containing arm).
  - The 3-year DFS rate was higher for patients with TNBC randomly assigned to the carboplatin arm (86.1% vs. 75.8%; HR, 0.56; 95% CI, 0.34−0.93), but OS did not differ.[104]
  - The more intensive regimen was also associated with increased toxicity and treatment discontinuations (39% vs. 48%).
2. The CALGB 40603 (https://www.cancer.gov/clinicaltrials/NCT00861705) trial (NCT00861705) compared an anthracycline/taxane backbone alone with an anthracycline/taxane backbone plus carboplatin in patients with stage II and stage III TNBC.[105][Level of evidence B3]
  - The pCR rate for the breast and axilla was 54% for the anthracycline/taxane backbone-plus-carboplatin group versus 41% for the anthracycline/taxane backbone-alone group (P = .0029).

##### Immunotherapy

Evidence (adding pembrolizumab to a chemotherapy regimen in patients with stage II or stage III TNBC):

1. The randomized, double blind, phase III KEYNOTE-522 (https://www.cancer.gov/clinicaltrials/NCT03036488) trial (NCT03036488) evaluated the addition of immunotherapy to neoadjuvant chemotherapy for patients with stage II and stage III TNBC.[106][Level of evidence B1] Participants were randomly assigned in a 2:1 ratio to receive neoadjuvant chemotherapy (paclitaxel plus carboplatin, followed by doxorubicin plus cyclophosphamide) with either neoadjuvant and adjuvant pembrolizumab or neoadjuvant and adjuvant placebo. Co-primary end points were pCR rate and EFS. The pCR rate, as reported at the time of the first interim analysis for the first 602 participants (pembrolizumab arm, n = 401; placebo arm, n = 201), favored the pembrolizumab arm.
  - A pCR was observed in 64.8% of patients in the pembrolizumab arm and 51.2% of patients in the placebo arm (estimated treatment difference, 13.6%; 95% CI, 5.4%−21.8%; P < .001). Approximately 80% of tumors were positive for programmed death-ligand 1 (PD-L1), but the benefits of pembrolizumab regarding pCR were observed regardless of PD-L1 status.
  - At the time of the fourth interim analysis, when the median follow-up was 39 months, an improved EFS was observed in patients who received pembrolizumab. The 36-month EFS rate was 84.5% for patients who received pembrolizumab and 76.8% for patients who received placebo. (HR, 0.63; 95% CI, 0.48–0.82; P < .001).[107][Level of evidence B1]
  - EFS data are immature.
  - Grade 3 or higher adverse events occurred in 76.8% of participants in the pembrolizumab arm and 72.2% of participants in the placebo arm. Serious treatment-related adverse events occurred in 32.5% of participants in the pembrolizumab arm and 19.5% of participants in the placebo arm. Grade 3 or higher skin rashes, infusion reactions, and adrenal insufficiency were more frequent in the pembrolizumab arm.

#### Postoperative therapy for TNBC

For patients who undergo surgery first, combination chemotherapy is typically given in the adjuvant setting. While there is no established standard therapy in this setting, the following trial provides evidence that a non–anthracycline-based regimen may be suitable:

Evidence (adjuvant non–anthracycline-containing regimens):

1. The PATTERN (https://www.cancer.gov/clinicaltrials/NCT01216111) trial (NCT01216111) compared an anthracycline-based regimen (cyclophosphamide, 5-FU, epirubicin, and docetaxel [CEF-T]) with paclitaxel and carboplatin (PCb) in 647 Chinese women with TNBC who had completed definitive surgery. The primary end point was DFS.[108]
  - At a median follow-up of 62 months, the 5-year DFS rate was 86.5% for patients who received PCb and 80.3% for patients who received CEF-T (HR, 0.65; 95% CI, 0.44–0.96; P = .03).[108][Level of evidence B1]
  - There was no statistically significant difference in OS between the groups (HR, 0.71; 95% CI, 0.42–1.22; P = .22).

##### Capecitabine therapy

Capecitabine therapy increased DFS when given after conventional adjuvant therapy.

Evidence (capecitabine therapy for patients who have not been treated with preoperative systemic therapy):

1. The SYSUCC-001 (https://www.cancer.gov/clinicaltrials/NCT01112826) trial (NCT01112826) included 443 women (434 analyzed) with TNBC from 13 Chinese institutions. The women had received adjuvant chemotherapy and were randomly assigned to receive either no further therapy or capecitabine at a dose of 650 mg/m^2^ twice daily for 1 year. The primary study end point was DFS.[109]
  - After a median follow-up of 61 months, the 5-year DFS rate was 82.5% for patients who received capecitabine maintenance therapy compared with 73.0% for patients who received no further therapy (HR, 0.64; 95% CI, 0.42–0.95; P = .03).[109][Level of evidence B1]
  - Forty-five percent of patients who received capecitabine developed hand-foot syndrome, which was grade 3 in 7.7% of patients.
  - The rate of patients who completed 1 year of therapy was 82.8%.

Evidence (capecitabine therapy for patients who have been treated with preoperative systemic therapy):

1. In a study conducted in Japan and Korea, 910 women with HER2-negative breast cancers were randomly assigned in a nonblinded fashion to receive six to eight 3-week cycles of capecitabine or no further chemotherapy. Patients had residual disease after preoperative chemotherapy with anthracyclines, taxanes, or both, and 30% of the patients also had hormone receptor–negative disease. The primary end point was DFS.[110] The study was terminated because of the results of a planned interim analysis, and a final analysis was done.
  - In the final analysis, which included 887 eligible patients the 5-year DFS rate was 74.1% in the capecitabine group and 67.6% in the no-further-chemotherapy group (HR, 0.70; 95% CI, 0.53–0.92; P = .01).[Level of evidence B1]
  - OS was a secondary end point. The 5-year OS rate was 89.2% in the capecitabine group and 83.6% in the no-further-chemotherapy group (HR, 0.59; 95% CI, 0.39–0.90; P = .01).
  - In a subset analysis, OS was significantly prolonged only in the patients with hormone receptor–negative disease. Among those patients, the 5-year OS rate was 78.8% in the capecitabine group and 70.3% in the no-further-chemotherapy group (HR, 0.52; 95% CI, 0.30–0.90).
  - In the capecitabine group, 73.4% of the patients experienced hand-foot syndrome of varying degrees of severity.

These approaches should be considered for patients with residual disease after preoperative therapy. Patients may also consider participation in clinical trials of novel therapies. Clinical trials for this patient population have included EA1131 (https://www.cancer.gov/clinicaltrials/NCT02445391) (NCT02445391), a phase III clinical trial that randomly assigned patients with residual basal-like TNBC after preoperative therapy to receive either platinum-based chemotherapy or capecitabine, and S1418/BR006 (https://www.cancer.gov/clinicaltrials/NCT02954874) (NCT02954874), a phase III trial that evaluated the efficacy of pembrolizumab as adjuvant therapy for patients with residual TNBC (≥1 cm invasive cancer or residual nodes) after preoperative therapy. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

##### Immunotherapy

One completed trial showed no benefit to adding atezolizumab to postoperative chemotherapy.

Evidence (postoperative atezolizumab):

1. In the ALEXANDRA/IMpassion030 (https://www.cancer.gov/clinicaltrials/NCT03498716) trial (NCT03498716), 2,199 women who had not received preoperative systemic therapy were randomly assigned postoperatively to receive chemotherapy with or without atezolizumab. The chemotherapy regimen included paclitaxel and cyclophosphamide with doxorubicin or epirubicin. The primary end point was IDFS. Trial accrual was prematurely terminated by the data safety monitoring committee for futility.[111]
  - The final analysis demonstrated no benefit in IDFS with the addition of atezolizumab (HR, 1.11; 95% CI, 0.87–1.42; P = .38).[111][Level of evidence B1]

### Stages I, II, and III HER2-Positive Breast Cancer

Patients with HER2-positive breast cancer who are also hormone receptor–positive receive hormone therapy as described in the Stages I, II, and III HER2-Negative Hormone Receptor–Positive Breast Cancer section.

#### Preoperative therapy for HER2-positive breast cancer

After the success in the adjuvant setting, initial reports from phase II studies indicated improved pCR rates when trastuzumab, a monoclonal antibody that binds the extracellular domain of HER2, was added to preoperative anthracycline/taxane–based regimens.[112][Level of evidence B3] This has been confirmed in phase III studies.[113,114]

##### Trastuzumab

Evidence (trastuzumab):

1. The phase III NeOAdjuvant Herceptin (NOAH) study randomly assigned patients with HER2-positive locally advanced or inflammatory breast cancers to undergo preoperative chemotherapy with or without 1 year of trastuzumab therapy.[114][Level of evidence A1]
  - Study results confirmed that the addition of trastuzumab to preoperative chemotherapy resulted not only in improved clinical responses (87% vs. 74%) and pathological responses (breast and axilla, 38% vs. 19%) but also in EFS, the primary outcome.[114][Level of evidence A1]
  - After a median follow-up of 5.4 years, the EFS benefit was 58% with the addition of trastuzumab to chemotherapy (95% CI, 48%–66%) and 43% (95% CI, 34%–52%) in patients in the chemotherapy group. The unadjusted HR for EFS between the two randomized HER2-positive treatment groups was 0.64 (95% CI, 0.44–0.93; two-sided log-rank P = .016). EFS was strongly associated with pCR in patients who received trastuzumab.[115]
  - Symptomatic cardiac failure occurred in two patients who received concurrent doxorubicin and trastuzumab for two cycles. Close cardiac monitoring of left ventricular ejection fraction (LVEF) and the total dose of doxorubicin not exceeding 180 mg/m^2^ accounted for the relatively low number of declines in LVEF and only two cardiac events. For more information, see the Cardiac Toxic Effects With Adjuvant Trastuzumab section.[114][Level of evidence B1]
2. Due to concern about coadministration of trastuzumab and anthracyclines, a phase III trial (Z1041 (https://www.cancer.gov/clinicaltrials/NCT00513292) [NCT00513292]) randomly assigned patients with operable HER2-positive breast cancer to receive trastuzumab sequential to or concurrent with the anthracycline component (5-FU, epirubicin, and cyclophosphamide [FEC]) of the preoperative chemotherapy regimen.[116][Level of evidence B3]
  - The primary outcome was pCR. There was no significant difference in pCR rate in the breast between the arms (56.5% sequential, 54.2% concurrent; difference, 2.3%; 95% CI, -9.3 to 13.9).
  - Asymptomatic declines in LVEF during preoperative chemotherapy were identified in similar proportions of patients in each arm.
  - DFS and OS were secondary outcomes. After median follow-up of 5.1 years, there was no difference in DFS (HR, 1.02; 95% CI, 0.56−1.83; P = .96) or OS (HR, 1.17; 95% CI, 0.48−2.88; P = .73) between the sequential and concurrent arms.[117]
  - Based on these findings, concurrent administration of trastuzumab with anthracyclines is not warranted.

A subcutaneous (SQ) formulation of trastuzumab has also been approved.

The SafeHer (https://www.cancer.gov/clinicaltrials/NCT01566721) trial (NCT01566721) evaluated the safety and tolerability of self-administered versus clinician-administered SQ trastuzumab in patients with stage I to stage III HER2-positive breast cancer.[118] Chemotherapy was administered concurrently or sequentially.

A phase III (HannaH (https://www.cancer.gov/clinicaltrials/NCT00950300) [NCT00950300]) trial also demonstrated that the pharmacokinetics and efficacy of preoperative SQ trastuzumab is noninferior to the IV formulation. This international open-label trial (n = 596) randomly assigned women with operable, locally advanced, or inflammatory HER2-positive breast cancer to undergo preoperative chemotherapy (anthracycline/taxane–based), with either SQ-administered or IV-administered trastuzumab every 3 weeks before surgery. Patients received adjuvant trastuzumab to complete 1 year of therapy.[119][Level of evidence B1] The pCR rates between the arms differed by 4.7% (95% CI, 4.0%–13.4%); 40.7% in the IV-administered group versus 45.4% in the SQ-administered group, demonstrating noninferiority for the SQ formulation. EFS and OS were secondary end points. The 6-year EFS rate was 65% in both arms (HR, 0.98; 95% CI, 0.74−1.29). The 6-year OS rate was 84% in both arms (HR, 0.94; 95% CI, 0.61−1.45).[120]

Newer HER2-targeted therapies (lapatinib, pertuzumab) have also been investigated. It appears that dual targeting of the HER2 receptor results in an increase in pCR rate. However, no survival advantage has been demonstrated to date with this approach.[121,122]

##### Pertuzumab

Pertuzumab is a humanized monoclonal antibody that binds to a distinct epitope on the extracellular domain of the HER2 receptor and inhibits dimerization. Pertuzumab, in combination with trastuzumab with or without chemotherapy, has been evaluated in two preoperative clinical trials to improve on the pCR rates observed with trastuzumab and chemotherapy.

Evidence (pertuzumab):

1. In the open-label, randomized, phase II NeoSPHERE (https://www.cancer.gov/clinicaltrials/NCT00545688) trial (NCT00545688),[121] 417 women with tumors that were larger than 2 cm or node-positive, and who had HER2-positive breast cancer, were randomly assigned to one of four preoperative regimens:[121][Level of evidence B3]
  a. Docetaxel plus trastuzumab.
  b. Docetaxel plus trastuzumab and pertuzumab.
  c. Pertuzumab plus trastuzumab.
  d. Docetaxel plus pertuzumab.
  The following results were observed:
  - The pCR rates were 29% for docetaxel plus trastuzumab, 46% for docetaxel plus trastuzumab and pertuzumab, 17% for pertuzumab plus trastuzumab, and 24% for docetaxel plus pertuzumab. Therefore, the highest pCR rate was seen in the preoperative treatment arm with dual HER2 blockade plus chemotherapy.
  - The addition of pertuzumab to the docetaxel-plus-trastuzumab combination did not appear to increase toxic effects, including the risk of cardiac adverse events.
  - Despite the high pCR rate observed with dual HER2 blockade plus chemotherapy, PFS and DFS rates were not improved, although the NeoSPHERE trial was not powered to detect differences in long-term efficacy outcomes.[123]
2. The open-label, randomized, phase II TRYPHAENA (https://www.cancer.gov/clinicaltrials/NCT00976989) trial (NCT00976989) sought to evaluate the tolerability and activity associated with trastuzumab and pertuzumab.[124][Level of evidence B3] All 225 women with tumors that were larger than 2 cm or node positive, and who had operable, locally advanced, or inflammatory HER2-positive breast cancer, were randomly assigned to one of three preoperative regimens:
  a. Concurrent FEC plus trastuzumab plus pertuzumab (×3) followed by concurrent docetaxel plus trastuzumab plus pertuzumab.
  b. FEC alone (×3) followed by concurrent docetaxel plus trastuzumab plus pertuzumab (×3).
  c. Concurrent docetaxel and carboplatin plus trastuzumab plus pertuzumab (×6).
  The following results were observed:
  - The pCR rate was equivalent across all three treatment arms: (62% for concurrent FEC plus trastuzumab plus pertuzumab followed by concurrent docetaxel plus trastuzumab plus pertuzumab; 57% for FEC alone followed by concurrent docetaxel plus trastuzumab plus pertuzumab; and 66% for concurrent docetaxel and carboplatin plus trastuzumab plus pertuzumab).
  - All three arms were associated with a low incidence of cardiac adverse events of 5% or less.

Because of these studies, the FDA granted accelerated approval of pertuzumab as part of a preoperative treatment for women with early-stage, HER2-positive breast cancer whose tumors are larger than 2 cm or node-positive.

The FDA approval of pertuzumab was subsequently converted to regular approval following the results of the confirmatory APHINITY (https://www.cancer.gov/clinicaltrials/NCT01358877) trial (NCT01358877), a randomized, phase III, adjuvant study for women with HER2-positive breast cancer. Study results demonstrated improved IDFS with the combination of chemotherapy and dual HER2-targeted therapy with pertuzumab plus trastuzumab compared with chemotherapy and trastuzumab alone.[125] Pertuzumab is now approved both in combination with trastuzumab and chemotherapy for the neoadjuvant therapy of locally advanced, inflammatory, or early-stage HER2-positive breast cancer, which is larger than 2 cm or node-positive, as part of a complete treatment regimen and in combination with chemotherapy and trastuzumab as adjuvant treatment for HER2-positive early breast cancer at a high risk of recurrence.

The randomized, open-label, multicenter TRAIN-2 (https://www.cancer.gov/clinicaltrials/NCT01996267) trial (NCT01996267) evaluated the optimal chemotherapy backbone to use with neoadjuvant pertuzumab and trastuzumab in patients with stage II to stage III HER2-positive breast cancer (i.e., an anthracycline-containing or non–anthracycline-containing regimen).[126,127][Level of evidence B3] A total of 438 patients were randomly assigned to receive one of the following regimens:

a. FEC every 3 weeks for three cycles followed by paclitaxel and carboplatin every 3 weeks for six cycles. Paclitaxel was administered on days 1 and 8 and carboplatin was administered either on day 1 alone or on days 1 and 8. Trastuzumab and pertuzumab were given every 3 weeks throughout chemotherapy. Primary prophylaxis with filgrastim was not administered during the FEC portion of therapy.
b. Paclitaxel and carboplatin according to the same schedule for nine cycles. Trastuzumab and pertuzumab were given every 3 weeks throughout chemotherapy.

The primary end point was pCR (ypT0/is, ypN0). Secondary end point data on EFS, OS, toxicity, and breast conservation are available. The following results were observed:

- There was no statistically significant difference in the proportion of patients with pCR between the anthracycline (67%) and non-anthracycline (68%) arm.
- There was no difference in the proportion of patients in each arm who underwent breast-conserving surgery.
- Irrespective of hormone receptor and nodal status, 3-year EFS estimates were 92.7% in the anthracycline group and 93.6% in the non-anthracycline group. The 3-year OS estimates were 97.7% in the anthracycline group and 98.2% in the non-anthracycline group.
- A decline in LVEF of 10% or more from baseline to less than 50% was more common in patients who received anthracyclines than those who did not (7.7% vs. 3.2%; P = .04).
- Two patients treated with anthracyclines developed acute leukemia.
- There was no difference in the proportion of patients in each arm with at least grade 2 peripheral neuropathy: 66 patients (30%) in the anthracycline arm versus 68 patients (31%) in the non-anthracycline arm.
- Grade 4 neutropenia and febrile neutropenia were more common in the anthracycline arm (23 patients [10%]) than in the non-anthracycline arm (3 patients [1%], P < .0001).

#### Postoperative therapy for HER2-positive breast cancer

Patients who have not been treated with preoperative systemic therapy.

Standard treatment for HER2-positive early breast cancer is 1 year of adjuvant HER2-targeted therapy.

##### Trastuzumab

Several phase III clinical trials have addressed the role of the anti-HER2 antibody, trastuzumab, as adjuvant therapy for patients with HER2-overexpressing cancers. Study results confirm the benefit of 1 year of adjuvant trastuzumab therapy.

Evidence (including duration of trastuzumab therapy for patients who have not been treated with preoperative systemic therapy):

1. The Herceptin Adjuvant (HERA) (BIG-01-01 (https://www.cancer.gov/clinicaltrials/NCT00045032) [NCT00045032]) trial examined the efficacy of trastuzumab as adjuvant treatment for HER2-positive breast cancer if used after completion of the primary treatment. For most patients, primary treatment consisted of an anthracycline-containing chemotherapy regimen given preoperatively or postoperatively, with or without locoregional radiation therapy. Trastuzumab was given every 3 weeks starting within 7 weeks of the completion of primary treatment.[128][Level of evidence A1] Patients were randomly assigned to one of three study arms:
  a. Observation (n = 1,693).
  b. 1 year of trastuzumab (n = 1,694).
  c. 2 years of trastuzumab (n = 1,694).
  Of the patients in the group comparing 1 year of trastuzumab versus observation, the median age was 49 years, about 33% had node-negative disease, and nearly 50% had hormone receptor–negative disease.[129]
  The following results were observed for patients assigned to 1 year of trastuzumab versus patients assigned to observation:
  - After a median follow-up of 11 years,[129] 1 year of trastuzumab improved DFS (10-year DFS rate, 72% vs. 66%; HR, 0.76; 95% CI, 0.68–0.86; P < .0001), despite a crossover of 52% of the patients on observation.
  - One year of trastuzumab also improved OS (12-year OS rate, 79% vs. 73%; HR, 0.74; 95% CI, 0.64–0.86; P < .0001).[129][Level of evidence A1]
  The following results were observed for patients assigned to 1 year of trastuzumab versus patients assigned to 2 years of trastuzumab:
  - After a median follow-up of 11 years, there was no DFS benefit to an additional year of trastuzumab (HR, 1.02; 95% CI, 0.89–1.17).
  Symptomatic cardiac events occurred in 1% of the patients who received trastuzumab and in 0.1% of the observation group.
2. In the combined analysis of the NSABP-B-31 (https://www.cancer.gov/clinicaltrials/NCT00004067) (NCT00004067) and intergroup NCCTG-N9831 (https://www.cancer.gov/clinicaltrials/NCT00005970) (NCT00005970) trials, trastuzumab was given weekly, concurrently, or immediately after the paclitaxel component of the AC with paclitaxel regimen.[130,131][Level of evidence A1]
  - The HERA results were confirmed in a joint analysis of the two studies, with a combined enrollment of 3,676 patients. A highly statistically significant improvement in DFS (3-year DFS rate, 87% vs. 75%; HR, 0.48; P < .001) was observed, as was a significant improvement in OS (3-year OS rate, 94.3% in the trastuzumab group vs. 91.7% in the control group; 4-year OS rate, 91.4% in the trastuzumab group vs. 86.6% in the control group; HR, 0.67; P = .015).[130]
  - Patients treated with trastuzumab experienced a longer DFS, with a 52% lower risk of a DFS event (HR, 0.48; 95% CI, 0.39–0.59; P < .001), corresponding to an absolute difference in DFS of 11.8% at 3 years and 18% at 4 years. The risk of distant recurrence in patients treated with trastuzumab was 53% lower (HR, 0.47; 95% CI, 0.37–0.61; P < .001), and the risk of death was 33% lower (HR, 0.67; 95% CI, 0.48–0.93; P = .015).[130]
  - In an updated analysis with a median follow-up of 8.4 years, the addition of trastuzumab to chemotherapy led to a 37% relative improvement in OS (HR, 0.63; 95% CI, 0.54–0.73; P < .001) and an increase in the 10-year OS rate from 75.2% to 84%.[132]
3. In the BCIRG-006 (https://www.cancer.gov/clinicaltrials/NCT00021255) trial (NCT00021255), 3,222 women with early-stage HER2-overexpressing breast cancer were randomly assigned to receive AC followed by docetaxel (AC-T), AC followed by docetaxel plus trastuzumab (AC-T plus trastuzumab), or docetaxel, carboplatin, plus trastuzumab (TCH, a non–anthracycline-containing regimen).[133][Level of evidence A1]
  - A significant DFS and OS benefit was seen in both groups treated with trastuzumab compared with the control group that did not receive trastuzumab.
  - For patients receiving AC-T plus trastuzumab, the 5-year DFS rate was 84% (HR for the comparison with AC-T, 0.64; P < .001), and the OS rate was 92% (HR, 0.63; P < .001). For patients receiving TCH, the 5-year DFS rate was 81% (HR, 0.75; P = .04), and the OS rate was 91% (HR, 0.77; P = .04). The control group had a 5-year DFS rate of 75% and an OS rate of 87%.
  - The authors stated that there was no significant difference in DFS or OS between the two trastuzumab-containing regimens. However, the study was not powered to detect equivalence between the two trastuzumab-containing regimens.
  - The rates of congestive heart failure and cardiac dysfunction were significantly higher in the group receiving AC-T plus trastuzumab than in the TCH group (P < .001).
  - These trial findings raise the question of whether anthracyclines are needed for the adjuvant treatment of HER2-overexpressing breast cancer. The group receiving AC-trastuzumab showed a small but not statistically significant benefit over TCH.
  - This trial supports the use of TCH as an alternative adjuvant regimen for women with early-stage HER2-overexpressing breast cancer, particularly in those with concerns about cardiac toxic effects.
4. The Finland Herceptin (FINHER) study assessed the impact of a much shorter course of trastuzumab. In this trial, 232 women younger than 67 years with node-positive or high-risk (>2 cm tumor size) node-negative HER2-overexpressing breast cancer were given nine weekly infusions of trastuzumab concurrently with docetaxel or vinorelbine followed by FEC.[134][Level of evidence A1]
  - At a 3-year median follow-up, the risk of recurrence and/or death was significantly reduced in patients receiving trastuzumab (3-year DFS rate, 89% vs. 78%; HR, 0.41; P = .01; 95% CI, 0.21–0.83).
  - The difference in OS (HR, 0.41) was not statistically significant (P = .07; 95% CI, 0.16–1.08).
5. Several studies have compared 6 months of trastuzumab administration to 12 months.[135-137]
  a. In an interim analysis of the PHARE (https://www.cancer.gov/clinicaltrials/NCT00381901) trial (NCT00381901), the 2-year DFS rate was 93.8% (95% CI, 92.6%–94.9%) in the 12-month group and 91.1% (89.7%–92.4%) in the 6-month group (HR, 1.28; 95% CI, 1.05–1.56; noninferiority, P = .29).[135][Level of evidence A1]
    - In the final analysis, after 704 events were observed, the adjusted HR was 1.08 (95% CI, 0.93–1.25), and the prespecified noninferiority HR of 1.15 was not excluded.
  b. Similar results were noted in a much smaller study of 481 patients led by the Hellenic Oncology Research Group.[136][Level of evidence A1]
  c. In contrast, the PERSEPHONE (https://www.cancer.gov/clinicaltrials/NCT00712140) trial (NCT00712140), which enrolled 4,088 patients who experienced 512 DFS events at the time of analysis, excluded its prespecified noninferiority margin (HR, 1.07; 90% CI, 0.93−1.24; noninferiority, P = .011).[137][Level of evidence A1]
6. The SOLD (https://www.cancer.gov/clinicaltrials/NCT00593697) trial (NCT00593697) compared 9 weeks of trastuzumab with 1 year of trastuzumab in 2,174 women with HER2-positive breast cancer.[138]
  - Noninferiority of the 9-week treatment could not be demonstrated for DFS (HR, 1.39; 2-sided 90% CI, 1.12−1.72).[138][Level of evidence B1]
7. A meta-analysis that included these trials concluded that, with respect to OS, 1 year of trastuzumab was superior to a shorter duration of therapy; however, there was no significant benefit of 1 year of therapy in patients with low-risk disease.[139][Level of evidence A1]

Several studies have evaluated the use of SQ trastuzumab in the neoadjuvant and adjuvant settings.

##### Pertuzumab

Pertuzumab is a humanized monoclonal antibody that binds to a distinct epitope on the extracellular domain of the HER2 receptor and inhibits dimerization. Its use, in combination with trastuzumab, has been evaluated in a randomized trial in the postoperative setting.

Evidence (pertuzumab):

1. The Breast Intergroup (BIG) trial enrolled 4,805 women with HER2-positive cancer in a blinded comparison study. Patients received 12 months of trastuzumab plus placebo versus 12 months of trastuzumab plus pertuzumab, which were given in conjunction with standard chemotherapy and hormone therapy. The primary end point was IDFS.[125]
  - At the time of the final analysis, the 3-year IDFS rate was 94.1% in the trastuzumab-pertuzumab group and 93.2% in the trastuzumab-placebo group (HR, 0.81; 95% CI, 0.66–1.00; P = .045).
  - There was no statistically significant difference in OS (a secondary end point) at the first interim analysis. The same observation was made at the third interim analysis.[140]
  - Patients who received pertuzumab had more grade 3 diarrhea (9.8% vs. 3.7%) and were more likely to develop heart failure (0.6% vs. 0.2%) than those who received placebo.

##### Trastuzumab emtansine (T-DM1)

Evidence (T-DM1 for patients who have received preoperative HER2-targeted therapy.):

1. In a phase III trial (KATHERINE (https://www.cancer.gov/clinicaltrials/NCT01772472) [NCT01772472]), 1,486 women with HER2-positive disease who received a preoperative taxane-containing chemotherapy (with or without an anthracycline) along with trastuzumab with or without a second HER2 targeted agent, but who had residual disease after surgery, were randomly assigned to receive 14 cycles of adjuvant trastuzumab or T-DM1. The primary end point was IDFS.[141][Level of evidence B1]
  - At the time of a planned interim analysis, IDFS was significantly higher in the T-DM1 group than in the trastuzumab group (HR_invasive disease or death_, 0.50; 95% CI, 0.39–0.64; P < .001; IDFS at 3 years, 88.3% vs. 77%).
  - Data on OS are immature and not significant (HR, 0.70; 95% CI, 0.47–1.05).
  - Patients receiving T-DM1 were more likely to discontinue treatment because of an adverse event (18% vs. 2.1%) and had a higher frequency of sensory neuropathy (18.6% vs. 6.9%), most cases of which had resolved at the time of the analysis.
  - On subgroup analysis, the benefit of T-DM1 was observed in all subgroups, including participants who received dual HER2-targeted therapy in the preoperative setting.

##### Neratinib

Neratinib is an irreversible tyrosine kinase inhibitor of HER1, HER2, and HER4, which has been approved by the FDA for the extended adjuvant treatment of patients with early-stage HER2-positive breast cancer, to follow adjuvant trastuzumab-based therapy.

Evidence (neratinib):

1. In the ExteNET (https://www.cancer.gov/clinicaltrials/NCT00878709) trial (NCT00878709), the safety and efficacy of 12 months of adjuvant neratinib was investigated in patients with early-stage HER2-positive breast cancer (n = 2,840) who had completed neoadjuvant trastuzumab up to 2 years before randomization. Patients received 240 mg of oral neratinib daily for 1 year or a placebo. The primary end point was IDFS.[142][Level of evidence A1]
  - After a median follow-up of 5.2 years (interquartile range, 2.1–5.3), patients in the neratinib group had significantly fewer IDFS events than those in the placebo group (neratinib group, 116 events vs. placebo group, 163 events; stratified HR, 0.73; 95% CI, 0.57–0.92; P = .0083). The 5-year IDFS rate was 90.2% (95% CI, 88.3%–91.8%) in the neratinib group and 87.7% (85.7%–89.4%) in the placebo group.[143]
  - OS data are not mature.
  - The most common grade 1 to 2 adverse events included diarrhea (neratinib, 55% vs. placebo, 34%), nausea (41% vs. 21%), fatigue (25% vs. 20%), vomiting (23% vs. 8%), and abdominal pain (22% vs. 10%). The FDA label recommends prophylactic loperamide during the first 56 days of therapy, and as needed thereafter to help manage diarrhea.
  - The most common grade 3 to 4 adverse event was diarrhea (neratinib, 40% vs. placebo, 2%). All other grade 3 to 4 adverse events occurred in 2% or less of patients.

#### Node-negative, small, HER2-positive breast cancer

There are no studies comparing different regimens in patients with node-negative, small, HER2-positive breast tumors. The following two large single-arm studies demonstrated outcomes that appear to be superior to previous results in similar patients who did not receive adjuvant therapy.

Evidence (combination regimens for node-negative, small, HER2-positive tumors):

1. The single-arm Adjuvant Paclitaxel and Trastuzumab (APT (https://www.cancer.gov/clinicaltrials/NCT00542451)) trial (NCT00542451) evaluated a non–anthracycline-containing regimen, paclitaxel and trastuzumab. The trial enrolled 410 women with node-negative, small (≤3 cm), HER2-positive tumors.[144]
  - After 6.5 years of follow-up, the DFS rate was 93% (95% CI, 90.4%–96.2%).[144][Level of evidence C2]
  - The 10-year DFS rate was 91.3% (95% CI, 88.3%–94.4%).[145]
2. The ATEMPT (https://www.cancer.gov/clinicaltrials/NCT01853748) trial (NCT01853748) compared paclitaxel and trastuzumab with T-DM1 in patients with node-negative HER2-positive tumors measuring 2 cm or smaller (patients with a single micrometastatic node were eligible). The goals of the trial were to determine if T-DM1 produced fewer clinically relevant toxicities and was associated with an acceptable 3-year IDFS rate. The trial randomly assigned 383 patients to the T-DM1 arm and 114 patients to the paclitaxel and trastuzumab arm.[146]
  - Although the types of toxicities differed in the two treatment arms, the total number of clinically relevant toxicities was nearly identical (46% in the T-DM1 arm vs. 47% in the paclitaxel and trastuzumab arm; P = .83). However, patients who received T-DM1 reported more favorable outcomes during treatment.
  - The 3-year IDFS rate for patients who received T-DM1 was 97.8% (95% CI, 96.3%–99.3%), which exceeded the protocol-specified rate of 95% to reject the null hypothesis (P = .0001).[146][Level of evidence C1] Results were similar at 5 years.[147]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Korde LA, Somerfield MR, Carey LA, et al.: Neoadjuvant Chemotherapy, Endocrine Therapy, and Targeted Therapy for Breast Cancer: ASCO Guideline. J Clin Oncol 39 (13): 1485-1505, 2021.33507815
Mauri D, Pavlidis N, Ioannidis JP: Neoadjuvant versus adjuvant systemic treatment in breast cancer: a meta-analysis. J Natl Cancer Inst 97 (3): 188-94, 2005.15687361
Early Breast Cancer Trialists' Collaborative Group (EBCTCG): Long-term outcomes for neoadjuvant versus adjuvant chemotherapy in early breast cancer: meta-analysis of individual patient data from ten randomised trials. Lancet Oncol 19 (1): 27-39, 2018.29242041
Cortazar P, Zhang L, Untch M, et al.: Pathological complete response and long-term clinical benefit in breast cancer: the CTNeoBC pooled analysis. Lancet 384 (9938): 164-72, 2014.24529560
Yau C, Osdoit M, van der Noordaa M, et al.: Residual cancer burden after neoadjuvant chemotherapy and long-term survival outcomes in breast cancer: a multicentre pooled analysis of 5161 patients. Lancet Oncol 23 (1): 149-160, 2022.34902335
Carlson RW, Allred DC, Anderson BO, et al.: Breast cancer. Clinical practice guidelines in oncology. J Natl Compr Canc Netw 7 (2): 122-92, 2009.19200416
Lyman GH, Temin S, Edge SB, et al.: Sentinel lymph node biopsy for patients with early-stage breast cancer: American Society of Clinical Oncology clinical practice guideline update. J Clin Oncol 32 (13): 1365-83, 2014.24663048
Boughey JC, Suman VJ, Mittendorf EA, et al.: Sentinel lymph node surgery after neoadjuvant chemotherapy in patients with node-positive breast cancer: the ACOSOG Z1071 (Alliance) clinical trial. JAMA 310 (14): 1455-61, 2013.24101169
Kuehn T, Bauerfeind I, Fehm T, et al.: Sentinel-lymph-node biopsy in patients with breast cancer before and after neoadjuvant chemotherapy (SENTINA): a prospective, multicentre cohort study. Lancet Oncol 14 (7): 609-18, 2013.23683750
Alvarado R, Yi M, Le-Petross H, et al.: The role for sentinel lymph node dissection after neoadjuvant chemotherapy in patients who present with node-positive breast cancer. Ann Surg Oncol 19 (10): 3177-84, 2012.22772869
Smith IC, Heys SD, Hutcheon AW, et al.: Neoadjuvant chemotherapy in breast cancer: significantly enhanced response with docetaxel. J Clin Oncol 20 (6): 1456-66, 2002.11896092
von Minckwitz G, Kümmel S, Vogel P, et al.: Intensified neoadjuvant chemotherapy in early-responding breast cancer: phase III randomized GeparTrio study. J Natl Cancer Inst 100 (8): 552-62, 2008.18398094
Bear HD, Anderson S, Brown A, et al.: The effect on tumor response of adding sequential preoperative docetaxel to preoperative doxorubicin and cyclophosphamide: preliminary results from National Surgical Adjuvant Breast and Bowel Project Protocol B-27. J Clin Oncol 21 (22): 4165-74, 2003.14559892
Vriens BE, Aarts MJ, de Vries B, et al.: Doxorubicin/cyclophosphamide with concurrent versus sequential docetaxel as neoadjuvant treatment in patients with breast cancer. Eur J Cancer 49 (15): 3102-10, 2013.23850450
Untch M, Jackisch C, Schneeweiss A, et al.: Nab-paclitaxel versus solvent-based paclitaxel in neoadjuvant chemotherapy for early breast cancer (GeparSepto-GBG 69): a randomised, phase 3 trial. Lancet Oncol 17 (3): 345-56, 2016.26869049
Gianni L, Mansutti M, Anton A, et al.: Comparing Neoadjuvant Nab-paclitaxel vs Paclitaxel Both Followed by Anthracycline Regimens in Women With ERBB2/HER2-Negative Breast Cancer-The Evaluating Treatment With Neoadjuvant Abraxane (ETNA) Trial: A Randomized Phase 3 Clinical Trial. JAMA Oncol 4 (3): 302-308, 2018.29327055
von Minckwitz G, Rezai M, Loibl S, et al.: Capecitabine in addition to anthracycline- and taxane-based neoadjuvant treatment in patients with primary breast cancer: phase III GeparQuattro study. J Clin Oncol 28 (12): 2015-23, 2010.20308671
Eiermann W, Paepke S, Appfelstaedt J, et al.: Preoperative treatment of postmenopausal breast cancer patients with letrozole: A randomized double-blind multicenter study. Ann Oncol 12 (11): 1527-32, 2001.11822750
Preece PE, Wood RA, Mackie CR, et al.: Tamoxifen as initial sole treatment of localised breast cancer in elderly women: a pilot study. Br Med J (Clin Res Ed) 284 (6319): 869-70, 1982.6802332
Smith IE, Dowsett M, Ebbs SR, et al.: Neoadjuvant treatment of postmenopausal breast cancer with anastrozole, tamoxifen, or both in combination: the Immediate Preoperative Anastrozole, Tamoxifen, or Combined with Tamoxifen (IMPACT) multicenter double-blind randomized trial. J Clin Oncol 23 (22): 5108-16, 2005.15998903
Early Breast Cancer Trialists' Collaborative Group (EBCTCG): Effects of chemotherapy and hormonal therapy for early breast cancer on recurrence and 15-year survival: an overview of the randomised trials. Lancet 365 (9472): 1687-717, 2005.15894097
De Laurentiis M, Cancello G, D'Agostino D, et al.: Taxane-based combinations as adjuvant chemotherapy of early breast cancer: a meta-analysis of randomized trials. J Clin Oncol 26 (1): 44-53, 2008.18165639
Henderson IC, Berry DA, Demetri GD, et al.: Improved outcomes from adding sequential Paclitaxel but not from escalating Doxorubicin dose in an adjuvant chemotherapy regimen for patients with node-positive primary breast cancer. J Clin Oncol 21 (6): 976-83, 2003.12637460 22524116
Mamounas EP, Bryant J, Lembersky B, et al.: Paclitaxel after doxorubicin plus cyclophosphamide as adjuvant chemotherapy for node-positive breast cancer: results from NSABP B-28. J Clin Oncol 23 (16): 3686-96, 2005.15897552
Martin M, Pienkowski T, Mackey J, et al.: Adjuvant docetaxel for node-positive breast cancer. N Engl J Med 352 (22): 2302-13, 2005.15930421
Perez EA: TAC--a new standard in adjuvant therapy for breast cancer? N Engl J Med 352 (22): 2346-8, 2005.15930427
Sparano JA, Wang M, Martino S, et al.: Weekly paclitaxel in the adjuvant treatment of breast cancer. N Engl J Med 358 (16): 1663-71, 2008.18420499
Citron ML, Berry DA, Cirrincione C, et al.: Randomized trial of dose-dense versus conventionally scheduled and sequential versus concurrent combination chemotherapy as postoperative adjuvant treatment of node-positive primary breast cancer: first report of Intergroup Trial C9741/Cancer and Leukemia Group B Trial 9741. J Clin Oncol 21 (8): 1431-9, 2003.12668651 22583945
Hudis C, Citron M, Berry D, et al.: Five year follow-up of INT C9741: dose-dense (DD) chemotherapy (CRx) is safe and effective. [Abstract] Breast Cancer Research and Treatment 94 (Suppl 1): A-41, 2005.
Citron ML, Berry DA, Cirrincione C, et al.: Dose-dense (DD) AC followed by paclitaxel is associated with moderate, frequent anemia compared to sequential (S) and/or less DD treatment: update by CALGB on Breast Cancer Intergroup Trial C9741 with ECOG, SWOG, & NCCTG. [Abstract] J Clin Oncol 23 (Suppl 16): A-620, 33s, 2005.
Del Mastro L, De Placido S, Bruzzi P, et al.: Fluorouracil and dose-dense chemotherapy in adjuvant treatment of patients with early-stage breast cancer: an open-label, 2 × 2 factorial, randomised phase 3 trial. Lancet 385 (9980): 1863-72, 2015.25740286
Early Breast Cancer Trialists' Collaborative Group (EBCTCG): Increasing the dose intensity of chemotherapy by more frequent administration or sequential scheduling: a patient-level meta-analysis of 37 298 women with early breast cancer in 26 randomised trials. Lancet 393 (10179): 1440-1452, 2019.30739743
Blum JL, Flynn PJ, Yothers G, et al.: Anthracyclines in Early Breast Cancer: The ABC Trials-USOR 06-090, NSABP B-46-I/USOR 07132, and NSABP B-49 (NRG Oncology). J Clin Oncol 35 (23): 2647-2655, 2017.28398846
Nitz U, Gluz O, Clemens M, et al.: West German Study PlanB Trial: Adjuvant Four Cycles of Epirubicin and Cyclophosphamide Plus Docetaxel Versus Six Cycles of Docetaxel and Cyclophosphamide in HER2-Negative Early Breast Cancer. J Clin Oncol 37 (10): 799-808, 2019.30785826
Gagliato Dde M, Gonzalez-Angulo AM, Lei X, et al.: Clinical impact of delaying initiation of adjuvant chemotherapy in patients with breast cancer. J Clin Oncol 32 (8): 735-44, 2014.24470007
Chavez-MacGregor M, Clarke CA, Lichtensztajn DY, et al.: Delayed Initiation of Adjuvant Chemotherapy Among Patients With Breast Cancer. JAMA Oncol 2 (3): 322-9, 2016.26659132
Burstein HJ, Temin S, Anderson H, et al.: Adjuvant endocrine therapy for women with hormone receptor-positive breast cancer: american society of clinical oncology clinical practice guideline focused update. J Clin Oncol 32 (21): 2255-69, 2014.24868023
Pan H, Gray R, Braybrooke J, et al.: 20-Year Risks of Breast-Cancer Recurrence after Stopping Endocrine Therapy at 5 Years. N Engl J Med 377 (19): 1836-1846, 2017.29117498
Colleoni M, Gelber S, Goldhirsch A, et al.: Tamoxifen after adjuvant chemotherapy for premenopausal women with lymph node-positive breast cancer: International Breast Cancer Study Group Trial 13-93. J Clin Oncol 24 (9): 1332-41, 2006.16505417
Fisher B, Dignam J, Bryant J, et al.: Five versus more than five years of tamoxifen for lymph node-negative breast cancer: updated findings from the National Surgical Adjuvant Breast and Bowel Project B-14 randomized trial. J Natl Cancer Inst 93 (9): 684-90, 2001.11333290 21231697
Stewart HJ, Prescott RJ, Forrest AP: Scottish adjuvant tamoxifen trial: a randomized study updated to 15 years. J Natl Cancer Inst 93 (6): 456-62, 2001.11259471 21159997
Tormey DC, Gray R, Falkson HC: Postchemotherapy adjuvant tamoxifen therapy beyond five years in patients with lymph node-positive breast cancer. Eastern Cooperative Oncology Group. J Natl Cancer Inst 88 (24): 1828-33, 1996.8961972 97121306
Davies C, Pan H, Godwin J, et al.: Long-term effects of continuing adjuvant tamoxifen to 10 years versus stopping at 5 years after diagnosis of oestrogen receptor-positive breast cancer: ATLAS, a randomised trial. Lancet 381 (9869): 805-16, 2013.23219286
Albain KS, Barlow WE, Ravdin PM, et al.: Adjuvant chemotherapy and timing of tamoxifen in postmenopausal patients with endocrine-responsive, node-positive breast cancer: a phase 3, open-label, randomised controlled trial. Lancet 374 (9707): 2055-63, 2009.20004966
Eisen A, Messersmith J, Franek M, et al.: Adjuvant ovarian ablation in the treatment of premenopausal women with early stage invasive breast cancer. Ontario, Canada: Cancer Care, 2010. Evidence-based Series # 1-9: Section 1. Available online. (https://www.cancercareontario.ca/en/guidelines-advice/types-of-cancer/1031) Last accessed April 24, 2025.
Adjuvant ovarian ablation versus CMF chemotherapy in premenopausal women with pathological stage II breast carcinoma: the Scottish trial. Scottish Cancer Trials Breast Group and ICRF Breast Unit, Guy's Hospital, London. Lancet 341 (8856): 1293-8, 1993.8098446 93261139
Schmid P, Untch M, Kossé V, et al.: Leuprorelin acetate every-3-months depot versus cyclophosphamide, methotrexate, and fluorouracil as adjuvant treatment in premenopausal patients with node-positive breast cancer: the TABLE study. J Clin Oncol 25 (18): 2509-15, 2007.17577027
Ejlertsen B, Mouridsen HT, Jensen MB, et al.: Similar efficacy for ovarian ablation compared with cyclophosphamide, methotrexate, and fluorouracil: from a randomized comparison of premenopausal patients with node-positive, hormone receptor-positive breast cancer. J Clin Oncol 24 (31): 4956-62, 2006.17075113
Wolff AC, Davidson NE: Still waiting after 110 years: the optimal use of ovarian ablation as adjuvant therapy for breast cancer. J Clin Oncol 24 (31): 4949-51, 2006.17075110
Boccardo F, Rubagotti A, Amoroso D, et al.: Cyclophosphamide, methotrexate, and fluorouracil versus tamoxifen plus ovarian suppression as adjuvant treatment of estrogen receptor-positive pre-/perimenopausal breast cancer patients: results of the Italian Breast Cancer Adjuvant Study Group 02 randomized trial. boccardo@hp380.ist.unige.it. J Clin Oncol 18 (14): 2718-27, 2000.10894871 20355118
Winer EP, Hudis C, Burstein HJ, et al.: American Society of Clinical Oncology technology assessment on the use of aromatase inhibitors as adjuvant therapy for women with hormone receptor-positive breast cancer: status report 2002. J Clin Oncol 20 (15): 3317-27, 2002.12149306 22144297
Tevaarwerk AJ, Wang M, Zhao F, et al.: Phase III comparison of tamoxifen versus tamoxifen plus ovarian function suppression in premenopausal women with node-negative, hormone receptor-positive breast cancer (E-3193, INT-0142): a trial of the Eastern Cooperative Oncology Group. J Clin Oncol 32 (35): 3948-58, 2014.25349302
Francis PA, Regan MM, Fleming GF, et al.: Adjuvant ovarian suppression in premenopausal breast cancer. N Engl J Med 372 (5): 436-46, 2015.25495490
Francis PA, Pagani O, Fleming GF, et al.: Tailoring Adjuvant Endocrine Therapy for Premenopausal Breast Cancer. N Engl J Med 379 (2): 122-137, 2018.29863451
Kim HA, Lee JW, Nam SJ, et al.: Adding Ovarian Suppression to Tamoxifen for Premenopausal Breast Cancer: A Randomized Phase III Trial. J Clin Oncol 38 (5): 434-443, 2020.31518174
Gnant M, Mlineritsch B, Stoeger H, et al.: Adjuvant endocrine therapy plus zoledronic acid in premenopausal women with early-stage breast cancer: 62-month follow-up from the ABCSG-12 randomised trial. Lancet Oncol 12 (7): 631-41, 2011.21641868
Pagani O, Regan MM, Walley BA, et al.: Adjuvant exemestane with ovarian suppression in premenopausal breast cancer. N Engl J Med 371 (2): 107-18, 2014.24881463
Francis PA, Fleming GF, Láng I, et al.: Adjuvant Endocrine Therapy in Premenopausal Breast Cancer: 12-Year Results From SOFT. J Clin Oncol 41 (7): 1370-1375, 2023.36493334
Bernhard J, Luo W, Ribi K, et al.: Patient-reported outcomes with adjuvant exemestane versus tamoxifen in premenopausal women with early breast cancer undergoing ovarian suppression (TEXT and SOFT): a combined analysis of two phase 3 randomised trials. Lancet Oncol 16 (7): 848-58, 2015.26092816
Dowsett M, Forbes JF, Bradley R, et al.: Aromatase inhibitors versus tamoxifen in early breast cancer: patient-level meta-analysis of the randomised trials. Lancet 386 (10001): 1341-52, 2015.26211827
The ATAC Trialists' Group. Arimidex, tamoxifen alone or in combination: Anastrozole alone or in combination with tamoxifen versus tamoxifen alone for adjuvant treatment of postmenopausal women with early breast cancer: first results of the ATAC randomised trial. Lancet 359 (9324): 2131-9, 2002.12090977 22086512
Howell A, Cuzick J, Baum M, et al.: Results of the ATAC (Arimidex, Tamoxifen, Alone or in Combination) trial after completion of 5 years' adjuvant treatment for breast cancer. Lancet 365 (9453): 60-2, 2005.15639680
Thürlimann B, Keshaviah A, Coates AS, et al.: A comparison of letrozole and tamoxifen in postmenopausal women with early breast cancer. N Engl J Med 353 (26): 2747-57, 2005.16382061
Coates AS, Keshaviah A, Thürlimann B, et al.: Five years of letrozole compared with tamoxifen as initial adjuvant therapy for postmenopausal women with endocrine-responsive early breast cancer: update of study BIG 1-98. J Clin Oncol 25 (5): 486-92, 2007.17200148
Boccardo F, Rubagotti A, Guglielmini P, et al.: Switching to anastrozole versus continued tamoxifen treatment of early breast cancer. Updated results of the Italian tamoxifen anastrozole (ITA) trial. Ann Oncol 17 (Suppl 7): vii10-4, 2006.16760270
Jakesz R, Jonat W, Gnant M, et al.: Switching of postmenopausal women with endocrine-responsive early breast cancer to anastrozole after 2 years' adjuvant tamoxifen: combined results of ABCSG trial 8 and ARNO 95 trial. Lancet 366 (9484): 455-62, 2005 Aug 6-12.16084253
Boccardo F, Rubagotti A, Aldrighetti D, et al.: Switching to an aromatase inhibitor provides mortality benefit in early breast carcinoma: pooled analysis of 2 consecutive trials. Cancer 109 (6): 1060-7, 2007.17295293
Coombes RC, Hall E, Gibson LJ, et al.: A randomized trial of exemestane after two to three years of tamoxifen therapy in postmenopausal women with primary breast cancer. N Engl J Med 350 (11): 1081-92, 2004.15014181
Coombes RC, Kilburn LS, Snowdon CF, et al.: Survival and safety of exemestane versus tamoxifen after 2-3 years' tamoxifen treatment (Intergroup Exemestane Study): a randomised controlled trial. Lancet 369 (9561): 559-70, 2007.17307102
van de Velde CJ, Rea D, Seynaeve C, et al.: Adjuvant tamoxifen and exemestane in early breast cancer (TEAM): a randomised phase 3 trial. Lancet 377 (9762): 321-31, 2011.21247627
Regan MM, Neven P, Giobbie-Hurder A, et al.: Assessment of letrozole and tamoxifen alone and in sequence for postmenopausal women with steroid hormone receptor-positive breast cancer: the BIG 1-98 randomised clinical trial at 8·1 years median follow-up. Lancet Oncol 12 (12): 1101-8, 2011.22018631
De Placido S, Gallo C, De Laurentiis M, et al.: Adjuvant anastrozole versus exemestane versus letrozole, upfront or after 2 years of tamoxifen, in endocrine-sensitive breast cancer (FATA-GIM3): a randomised, phase 3 trial. Lancet Oncol 19 (4): 474-485, 2018.29482983
Goss PE, Ingle JN, Pritchard KI, et al.: Exemestane versus anastrozole in postmenopausal women with early breast cancer: NCIC CTG MA.27--a randomized controlled phase III trial. J Clin Oncol 31 (11): 1398-404, 2013.23358971
Goss PE, Hershman DL, Cheung AM, et al.: Effects of adjuvant exemestane versus anastrozole on bone mineral density for women with early breast cancer (MA.27B): a companion analysis of a randomised controlled trial. Lancet Oncol 15 (4): 474-82, 2014.24636210
Smith I, Yardley D, Burris H, et al.: Comparative Efficacy and Safety of Adjuvant Letrozole Versus Anastrozole in Postmenopausal Patients With Hormone Receptor-Positive, Node-Positive Early Breast Cancer: Final Results of the Randomized Phase III Femara Versus Anastrozole Clinical Evaluation (FACE) Trial. J Clin Oncol 35 (10): 1041-1048, 2017.28113032
Goss PE, Ingle JN, Martino S, et al.: A randomized trial of letrozole in postmenopausal women after five years of tamoxifen therapy for early-stage breast cancer. N Engl J Med 349 (19): 1793-802, 2003.14551341 22965325
Bryant J, Wolmark N: Letrozole after tamoxifen for breast cancer--what is the price of success? N Engl J Med 349 (19): 1855-7, 2003.14551339 22965323
Burstein HJ: Beyond tamoxifen--extending endocrine treatment for early-stage breast cancer. N Engl J Med 349 (19): 1857-9, 2003.14551340
Goss PE, Ingle JN, Martino S, et al.: Randomized trial of letrozole following tamoxifen as extended adjuvant therapy in receptor-positive breast cancer: updated findings from NCIC CTG MA.17. J Natl Cancer Inst 97 (17): 1262-71, 2005.16145047
Mamounas EP, Jeong JH, Wickerham DL, et al.: Benefit from exemestane as extended adjuvant therapy after 5 years of adjuvant tamoxifen: intention-to-treat analysis of the National Surgical Adjuvant Breast And Bowel Project B-33 trial. J Clin Oncol 26 (12): 1965-71, 2008.18332472
Goss PE, Ingle JN, Pritchard KI, et al.: Extending Aromatase-Inhibitor Adjuvant Therapy to 10 Years. N Engl J Med 375 (3): 209-19, 2016.27264120
Blok EJ, Kroep JR, Meershoek-Klein Kranenbarg E, et al.: Optimal Duration of Extended Adjuvant Endocrine Therapy for Early Breast Cancer; Results of the IDEAL Trial (BOOG 2006-05). J Natl Cancer Inst 110 (1): , 2018.28922787
Mamounas EP, Bandos H, Lembersky BC, et al.: Use of letrozole after aromatase inhibitor-based therapy in postmenopausal breast cancer (NRG Oncology/NSABP B-42): a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 20 (1): 88-99, 2019.30509771
Colleoni M, Luo W, Karlsson P, et al.: Extended adjuvant intermittent letrozole versus continuous letrozole in postmenopausal women with breast cancer (SOLE): a multicentre, open-label, randomised, phase 3 trial. Lancet Oncol 19 (1): 127-138, 2018.29158011
Tjan-Heijnen VCG, van Hellemond IEG, Peer PGM, et al.: Extended adjuvant aromatase inhibition after sequential endocrine therapy (DATA): a randomised, phase 3 trial. Lancet Oncol 18 (11): 1502-1511, 2017.29031778
Del Mastro L, Mansutti M, Bisagni G, et al.: Extended therapy with letrozole as adjuvant treatment of postmenopausal patients with early-stage breast cancer: a multicentre, open-label, randomised, phase 3 trial. Lancet Oncol 22 (10): 1458-1467, 2021.34543613
Gnant M, Fitzal F, Rinnerthaler G, et al.: Duration of Adjuvant Aromatase-Inhibitor Therapy in Postmenopausal Breast Cancer. N Engl J Med 385 (5): 395-405, 2021.34320285
Iwase T, Saji S, Iijima K, et al.: Postoperative Adjuvant Anastrozole for 10 or 5 Years in Patients With Hormone Receptor-Positive Breast Cancer: AERAS, a Randomized Multicenter Open-Label Phase III Trial. J Clin Oncol 41 (18): 3329-3338, 2023.37079878
Johnston SRD, Harbeck N, Hegg R, et al.: Abemaciclib Combined With Endocrine Therapy for the Adjuvant Treatment of HR+, HER2-, Node-Positive, High-Risk, Early Breast Cancer (monarchE). J Clin Oncol 38 (34): 3987-3998, 2020.32954927
Rastogi P, O'Shaughnessy J, Martin M, et al.: Adjuvant Abemaciclib Plus Endocrine Therapy for Hormone Receptor-Positive, Human Epidermal Growth Factor Receptor 2-Negative, High-Risk Early Breast Cancer: Results From a Preplanned monarchE Overall Survival Interim Analysis, Including 5-Year Efficacy Outcomes. J Clin Oncol 42 (9): 987-993, 2024.38194616
Martin M, Hegg R, Kim SB, et al.: Treatment With Adjuvant Abemaciclib Plus Endocrine Therapy in Patients With High-risk Early Breast Cancer Who Received Neoadjuvant Chemotherapy: A Prespecified Analysis of the monarchE Randomized Clinical Trial. JAMA Oncol 8 (8): 1190-1194, 2022.35653145
Slamon D, Lipatov O, Nowecki Z, et al.: Ribociclib plus Endocrine Therapy in Early Breast Cancer. N Engl J Med 390 (12): 1080-1091, 2024.38507751
Mayer EL, Dueck AC, Martin M, et al.: Palbociclib with adjuvant endocrine therapy in early breast cancer (PALLAS): interim analysis of a multicentre, open-label, randomised, phase 3 study. Lancet Oncol 22 (2): 212-222, 2021.33460574
Gnant M, Dueck AC, Frantal S, et al.: Adjuvant Palbociclib for Early Breast Cancer: The PALLAS Trial Results (ABCSG-42/AFT-05/BIG-14-03). J Clin Oncol 40 (3): 282-293, 2022.34874182
Coleman R, Powles T, Paterson A, et al.: Adjuvant bisphosphonate treatment in early breast cancer: meta-analyses of individual patient data from randomised trials. Lancet 386 (10001): 1353-61, 2015.26211824
Gnant M, Pfeiler G, Steger GG, et al.: Adjuvant denosumab in postmenopausal patients with hormone receptor-positive breast cancer (ABCSG-18): disease-free survival results from a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 20 (3): 339-351, 2019.30795951
Coleman R, Finkelstein DM, Barrios C, et al.: Adjuvant denosumab in early breast cancer (D-CARE): an international, multicentre, randomised, controlled, phase 3 trial. Lancet Oncol 21 (1): 60-72, 2020.31806543
Friedl TWP, Fehm T, Müller V, et al.: Prognosis of Patients With Early Breast Cancer Receiving 5 Years vs 2 Years of Adjuvant Bisphosphonate Treatment: A Phase 3 Randomized Clinical Trial. JAMA Oncol 7 (8): 1149-1157, 2021.34165508
Desnoyers A, Amir E, Tannock IF: Adjuvant Zoledronate Therapy for Women With Breast Cancer-Effective Treatment or Fool's Gold? JAMA Oncol 7 (8): 1121-1123, 2021.34165515
Tutt ANJ, Garber JE, Kaufman B, et al.: Adjuvant Olaparib for Patients with BRCA1- or BRCA2-Mutated Breast Cancer. N Engl J Med 384 (25): 2394-2405, 2021.34081848
Mittendorf EA, Jeruss JS, Tucker SL, et al.: Validation of a novel staging system for disease-specific survival in patients with breast cancer treated with neoadjuvant chemotherapy. J Clin Oncol 29 (15): 1956-62, 2011.21482989
Ganz PA, Bandos H, Španić T, et al.: Patient-Reported Outcomes in OlympiA: A Phase III, Randomized, Placebo-Controlled Trial of Adjuvant Olaparib in gBRCA1/2 Mutations and High-Risk Human Epidermal Growth Factor Receptor 2-Negative Early Breast Cancer. J Clin Oncol 42 (11): 1288-1300, 2024.38301187
von Minckwitz G, Schneeweiss A, Loibl S, et al.: Neoadjuvant carboplatin in patients with triple-negative and HER2-positive early breast cancer (GeparSixto; GBG 66): a randomised phase 2 trial. Lancet Oncol 15 (7): 747-56, 2014.24794243
Loibl S, Weber KE, Timms KM, et al.: Survival analysis of carboplatin added to an anthracycline/taxane-based neoadjuvant chemotherapy and HRD score as predictor of response-final results from GeparSixto. Ann Oncol 29 (12): 2341-2347, 2018.30335131
Sikov WM, Berry DA, Perou CM, et al.: Impact of the addition of carboplatin and/or bevacizumab to neoadjuvant once-per-week paclitaxel followed by dose-dense doxorubicin and cyclophosphamide on pathologic complete response rates in stage II to III triple-negative breast cancer: CALGB 40603 (Alliance). J Clin Oncol 33 (1): 13-21, 2015.25092775
Schmid P, Cortes J, Pusztai L, et al.: Pembrolizumab for Early Triple-Negative Breast Cancer. N Engl J Med 382 (9): 810-821, 2020.32101663
Schmid P, Cortes J, Dent R, et al.: Event-free Survival with Pembrolizumab in Early Triple-Negative Breast Cancer. N Engl J Med 386 (6): 556-567, 2022.35139274
Yu KD, Ye FG, He M, et al.: Effect of Adjuvant Paclitaxel and Carboplatin on Survival in Women With Triple-Negative Breast Cancer: A Phase 3 Randomized Clinical Trial. JAMA Oncol 6 (9): 1390-1396, 2020.32789480
Wang X, Wang SS, Huang H, et al.: Effect of Capecitabine Maintenance Therapy Using Lower Dosage and Higher Frequency vs Observation on Disease-Free Survival Among Patients With Early-Stage Triple-Negative Breast Cancer Who Had Received Standard Treatment: The SYSUCC-001 Randomized Clinical Trial. JAMA 325 (1): 50-58, 2021.33300950
Masuda N, Lee SJ, Ohtani S, et al.: Adjuvant Capecitabine for Breast Cancer after Preoperative Chemotherapy. N Engl J Med 376 (22): 2147-2159, 2017.28564564
Ignatiadis M, Bailey A, McArthur H, et al.: Adjuvant Atezolizumab for Early Triple-Negative Breast Cancer: The ALEXANDRA/IMpassion030 Randomized Clinical Trial. JAMA 333 (13): 1150-60, 2025.39883436
Buzdar AU, Ibrahim NK, Francis D, et al.: Significantly higher pathologic complete remission rate after neoadjuvant therapy with trastuzumab, paclitaxel, and epirubicin chemotherapy: results of a randomized trial in human epidermal growth factor receptor 2-positive operable breast cancer. J Clin Oncol 23 (16): 3676-85, 2005.15738535
Untch M, Rezai M, Loibl S, et al.: Neoadjuvant treatment with trastuzumab in HER2-positive breast cancer: results from the GeparQuattro study. J Clin Oncol 28 (12): 2024-31, 2010.20308670
Gianni L, Eiermann W, Semiglazov V, et al.: Neoadjuvant chemotherapy with trastuzumab followed by adjuvant trastuzumab versus neoadjuvant chemotherapy alone, in patients with HER2-positive locally advanced breast cancer (the NOAH trial): a randomised controlled superiority trial with a parallel HER2-negative cohort. Lancet 375 (9712): 377-84, 2010.20113825
Gianni L, Eiermann W, Semiglazov V, et al.: Neoadjuvant and adjuvant trastuzumab in patients with HER2-positive locally advanced breast cancer (NOAH): follow-up of a randomised controlled superiority trial with a parallel HER2-negative cohort. Lancet Oncol 15 (6): 640-7, 2014.24657003
Buzdar AU, Suman VJ, Meric-Bernstam F, et al.: Fluorouracil, epirubicin, and cyclophosphamide (FEC-75) followed by paclitaxel plus trastuzumab versus paclitaxel plus trastuzumab followed by FEC-75 plus trastuzumab as neoadjuvant treatment for patients with HER2-positive breast cancer (Z1041): a randomised, controlled, phase 3 trial. Lancet Oncol 14 (13): 1317-25, 2013.24239210
Buzdar AU, Suman VJ, Meric-Bernstam F, et al.: Disease-Free and Overall Survival Among Patients With Operable HER2-Positive Breast Cancer Treated With Sequential vs Concurrent Chemotherapy: The ACOSOG Z1041 (Alliance) Randomized Clinical Trial. JAMA Oncol 5 (1): 45-50, 2019.30193295
Gligorov J, Ataseven B, Verrill M, et al.: Safety and tolerability of subcutaneous trastuzumab for the adjuvant treatment of human epidermal growth factor receptor 2-positive early breast cancer: SafeHer phase III study's primary analysis of 2573 patients. Eur J Cancer 82: 237-246, 2017.28625777
Ismael G, Hegg R, Muehlbauer S, et al.: Subcutaneous versus intravenous administration of (neo)adjuvant trastuzumab in patients with HER2-positive, clinical stage I-III breast cancer (HannaH study): a phase 3, open-label, multicentre, randomised trial. Lancet Oncol 13 (9): 869-78, 2012.22884505
Jackisch C, Stroyakovskiy D, Pivot X, et al.: Subcutaneous vs Intravenous Trastuzumab for Patients With ERBB2-Positive Early Breast Cancer: Final Analysis of the HannaH Phase 3 Randomized Clinical Trial. JAMA Oncol 5 (5): e190339, 2019.30998824
Gianni L, Pienkowski T, Im YH, et al.: Efficacy and safety of neoadjuvant pertuzumab and trastuzumab in women with locally advanced, inflammatory, or early HER2-positive breast cancer (NeoSphere): a randomised multicentre, open-label, phase 2 trial. Lancet Oncol 13 (1): 25-32, 2012.22153890
Baselga J, Bradbury I, Eidtmann H, et al.: Lapatinib with trastuzumab for HER2-positive early breast cancer (NeoALTTO): a randomised, open-label, multicentre, phase 3 trial. Lancet 379 (9816): 633-40, 2012.22257673
Gianni L, Pienkowski T, Im YH, et al.: 5-year analysis of neoadjuvant pertuzumab and trastuzumab in patients with locally advanced, inflammatory, or early-stage HER2-positive breast cancer (NeoSphere): a multicentre, open-label, phase 2 randomised trial. Lancet Oncol 17 (6): 791-800, 2016.27179402
Schneeweiss A, Chia S, Hickish T, et al.: Pertuzumab plus trastuzumab in combination with standard neoadjuvant anthracycline-containing and anthracycline-free chemotherapy regimens in patients with HER2-positive early breast cancer: a randomized phase II cardiac safety study (TRYPHAENA). Ann Oncol 24 (9): 2278-84, 2013.23704196
von Minckwitz G, Procter M, de Azambuja E, et al.: Adjuvant Pertuzumab and Trastuzumab in Early HER2-Positive Breast Cancer. N Engl J Med 377 (2): 122-131, 2017.28581356
van Ramshorst MS, van der Voort A, van Werkhoven ED, et al.: Neoadjuvant chemotherapy with or without anthracyclines in the presence of dual HER2 blockade for HER2-positive breast cancer (TRAIN-2): a multicentre, open-label, randomised, phase 3 trial. Lancet Oncol 19 (12): 1630-1640, 2018.30413379
van der Voort A, van Ramshorst MS, van Werkhoven ED, et al.: Three-Year Follow-up of Neoadjuvant Chemotherapy With or Without Anthracyclines in the Presence of Dual ERBB2 Blockade in Patients With ERBB2-Positive Breast Cancer: A Secondary Analysis of the TRAIN-2 Randomized, Phase 3 Trial. JAMA Oncol 7 (7): 978-984, 2021.34014249
Piccart-Gebhart MJ, Procter M, Leyland-Jones B, et al.: Trastuzumab after adjuvant chemotherapy in HER2-positive breast cancer. N Engl J Med 353 (16): 1659-72, 2005.16236737
Cameron D, Piccart-Gebhart MJ, Gelber RD, et al.: 11 years' follow-up of trastuzumab after adjuvant chemotherapy in HER2-positive early breast cancer: final analysis of the HERceptin Adjuvant (HERA) trial. Lancet 389 (10075): 1195-1205, 2017.28215665
Romond EH, Perez EA, Bryant J, et al.: Trastuzumab plus adjuvant chemotherapy for operable HER2-positive breast cancer. N Engl J Med 353 (16): 1673-84, 2005.16236738
Perez E, Romond E, Suman V, et al.: Updated results of the combined analysis of NCCTG N9831 and NSABP B-31 adjuvant chemotherapy with/without trastuzumab in patiens with HER2-positive breast cancer. [Abstract] J Clin Oncol 25 (Suppl 18): 512, 6s, 2007.
Perez EA, Romond EH, Suman VJ, et al.: Trastuzumab plus adjuvant chemotherapy for human epidermal growth factor receptor 2-positive breast cancer: planned joint analysis of overall survival from NSABP B-31 and NCCTG N9831. J Clin Oncol 32 (33): 3744-52, 2014.25332249
Slamon D, Eiermann W, Robert N, et al.: Adjuvant trastuzumab in HER2-positive breast cancer. N Engl J Med 365 (14): 1273-83, 2011.21991949
Joensuu H, Kellokumpu-Lehtinen PL, Bono P, et al.: Adjuvant docetaxel or vinorelbine with or without trastuzumab for breast cancer. N Engl J Med 354 (8): 809-20, 2006.16495393
Pivot X, Romieu G, Debled M, et al.: 6 months versus 12 months of adjuvant trastuzumab in early breast cancer (PHARE): final analysis of a multicentre, open-label, phase 3 randomised trial. Lancet 393 (10191): 2591-2598, 2019.31178155
Mavroudis D, Saloustros E, Malamos N, et al.: Six versus 12 months of adjuvant trastuzumab in combination with dose-dense chemotherapy for women with HER2-positive breast cancer: a multicenter randomized study by the Hellenic Oncology Research Group (HORG). Ann Oncol 26 (7): 1333-40, 2015.25935793
Earl HM, Hiller L, Vallier AL, et al.: 6 versus 12 months of adjuvant trastuzumab for HER2-positive early breast cancer (PERSEPHONE): 4-year disease-free survival results of a randomised phase 3 non-inferiority trial. Lancet 393 (10191): 2599-2612, 2019.31178152
Joensuu H, Fraser J, Wildiers H, et al.: Effect of Adjuvant Trastuzumab for a Duration of 9 Weeks vs 1 Year With Concomitant Chemotherapy for Early Human Epidermal Growth Factor Receptor 2-Positive Breast Cancer: The SOLD Randomized Clinical Trial. JAMA Oncol 4 (9): 1199-1206, 2018.29852043
Inno A, Barni S, Ghidini A, et al.: One year versus a shorter duration of adjuvant trastuzumab for HER2-positive early breast cancer: a systematic review and meta-analysis. Breast Cancer Res Treat 173 (2): 247-254, 2019.30317424
Loibl S, Jassem J, Sonnenblick A, et al.: Adjuvant Pertuzumab and Trastuzumab in Early Human Epidermal Growth Factor Receptor 2-Positive Breast Cancer in the APHINITY Trial: Third Interim Overall Survival Analysis With Efficacy Update. J Clin Oncol 42 (31): 3643-3651, 2024.39259927
von Minckwitz G, Huang CS, Mano MS, et al.: Trastuzumab Emtansine for Residual Invasive HER2-Positive Breast Cancer. N Engl J Med 380 (7): 617-628, 2019.30516102
Chan A, Delaloge S, Holmes FA, et al.: Neratinib after trastuzumab-based adjuvant therapy in patients with HER2-positive breast cancer (ExteNET): a multicentre, randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 17 (3): 367-77, 2016.26874901
Martin M, Holmes FA, Ejlertsen B, et al.: Neratinib after trastuzumab-based adjuvant therapy in HER2-positive breast cancer (ExteNET): 5-year analysis of a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 18 (12): 1688-1700, 2017.29146401
Tolaney SM, Guo H, Pernas S, et al.: Seven-Year Follow-Up Analysis of Adjuvant Paclitaxel and Trastuzumab Trial for Node-Negative, Human Epidermal Growth Factor Receptor 2-Positive Breast Cancer. J Clin Oncol 37 (22): 1868-1875, 2019.30939096
Tolaney SM, Tarantino P, Graham N, et al.: Adjuvant paclitaxel and trastuzumab for node-negative, HER2-positive breast cancer: final 10-year analysis of the open-label, single-arm, phase 2 APT trial. Lancet Oncol 24 (3): 273-285, 2023.36858723
Tolaney SM, Tayob N, Dang C, et al.: Adjuvant Trastuzumab Emtansine Versus Paclitaxel in Combination With Trastuzumab for Stage I HER2-Positive Breast Cancer (ATEMPT): A Randomized Clinical Trial. J Clin Oncol 39 (21): 2375-2385, 2021.34077270
Tarantino P, Tayob N, Villacampa G, et al.: Adjuvant Trastuzumab Emtansine Versus Paclitaxel Plus Trastuzumab for Stage I Human Epidermal Growth Factor Receptor 2-Positive Breast Cancer: 5-Year Results and Correlative Analyses From ATEMPT. J Clin Oncol 42 (31): 3652-3665, 2024.38935923

## Toxicity of Systemic Therapy

### Capecitabine and Fluorouracil Dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[1,2] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[1-3] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[4-6] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[7] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[8]

### Toxicity of Adjuvant Chemotherapy

The acute toxicities of the drugs used for adjuvant chemotherapy are the same as those observed when these drugs are used in other treatment settings. However, because many patients with early breast cancer have prolonged survival, long-term adverse effects are particularly important in this setting. The following two toxicities are of special concern:

1. Cardiotoxicity from anthracyclines.
2. Marrow neoplasia. A study of 20,063 patients treated in National Comprehensive Cancer Network centers found an incidence of marrow neoplasia of 0.46 per 1,000 person-years in women treated with anthracycline- and/or cyclophosphamide-containing chemotherapy. This rate was significantly higher than the rate observed in women who were treated with surgery alone (hazard ratio, 6.8; 95% confidence interval [CI], 1.3–36.1).[9]

### Cardiac Toxic Effects With Adjuvant Trastuzumab

Cardiac events associated with adjuvant trastuzumab have been reported in multiple studies. Key study results include the following:

- In the HERA (BIG-01-01 (https://www.cancer.gov/clinicaltrials/NCT00045032)) trial, severe congestive heart failure (CHF) (New York Heart Association class III–IV) occurred in 0.6% of patients treated with trastuzumab.[10] Symptomatic CHF occurred in 1.7% of patients in the trastuzumab arm and 0.06% of patients in the observation arm.
- In the NSABP B-31 (https://www.cancer.gov/clinicaltrials/NCT00004067) trial (NCT00004067), 31 of 850 patients in the trastuzumab arm had confirmed symptomatic cardiac events, compared with 5 of 814 patients in the control arm.[11] The 3-year cumulative incidence of cardiac events for trastuzumab-treated patients was 4.1%, compared with 0.8% of patients in the control arm (95% CI, 1.7%–4.9%).
- In the NCCTG-N9831 (https://www.cancer.gov/clinicaltrials/NCT00005970) trial, 39 cardiac events were reported in the three arms over a 3-year period. The 3-year cumulative incidence of cardiac events was 0.35% in arm A (no trastuzumab), 3.5% in arm B (trastuzumab after paclitaxel), and 2.5% in arm C, (trastuzumab concomitant with paclitaxel).
- In the AVENTIS-TAX-GMA-302 (https://www.cancer.gov/clinicaltrials/NCT00768092) (BCIRG 006) trial (NCT00021255), clinically symptomatic cardiac events were detected in 0.38% of patients in the doxorubicin and cyclophosphamide (AC)/docetaxel (AC-D) arm, 1.87% of patients in the AC/docetaxel/trastuzumab (AC-DH) arm, and 0.37% of patients in the docetaxel/carboplatin/trastuzumab (DCbH) arm.[12] There was also a statistically significant higher incidence of asymptomatic and persistent decrease in left ventricular ejection fraction (LVEF) in the AC-DH arm than with either the AC-D or DCbH arms.
- In the FINHER trial, none of the patients who received trastuzumab experienced clinically significant cardiac events. LVEF was preserved in all of the women receiving trastuzumab, but the number of patients receiving adjuvant trastuzumab was very low.[13]

### Cardiac Toxic Effects With Pertuzumab and Lapatinib

Evidence (cardiac toxic effects with pertuzumab and lapatinib):

1. A pooled analysis of cardiac safety in 598 cancer patients treated with pertuzumab was performed using data supplied by Roche and Genentech.[14][Level of evidence C2]
  - Asymptomatic left ventricular systolic dysfunction was observed in 6.9% of patients receiving pertuzumab alone (n = 331; 95% CI, 4.5%–10.2%), 3.4% of patients receiving pertuzumab in combination with a non–anthracycline-containing chemotherapy (n = 175; 95% CI, 1.3%–7.3%), and 6.5% of patients receiving pertuzumab in combination with trastuzumab (n = 93; 95% CI, 2.4%–13.5%).
  - Symptomatic heart failure was observed in one patient (0.3%) who received pertuzumab alone, two patients (1.1%) who received pertuzumab in combination with a non–anthracycline-containing chemotherapy, and one patient (1.1%) who received pertuzumab in combination with trastuzumab.
2. A meta-analysis of randomized trials (n = 6) that evaluated the administration of anti-HER2 monotherapy (trastuzumab or lapatinib or pertuzumab) versus dual anti-HER2 therapy (trastuzumab plus lapatinib or trastuzumab plus pertuzumab) was performed.[15][Level of evidence C2]
  - LVEF decline was observed in 3.1% of the patients who received monotherapy (95% CI, 2.2%–4.4%) and 2.9% of the patients who received dual therapy (95% CI, 2.1%–4.1%).
  - Symptomatic heart failure was observed in 0.88% of the patients who received monotherapy (95% CI, 0.47%–1.64%) and 1.49% of the patients who received dual therapy (95% CI, 0.98%–2.23%).

### Toxicity of Endocrine Therapy

Tamoxifen

1. Long-term follow-up of the ATLAS (https://www.cancer.gov/clinicaltrials/NCT00003016) trial (NCT00003016) included toxicity data. Compared with 5 years, 10 years of tamoxifen therapy increased the risk of the following:[16]
  - Pulmonary embolus: relative risk (RR), 1.87 (95% CI, 1.13–3.07; P = .01).
  - Stroke: RR, 1.06 (95% CI, 0.83–1.36).
  - Ischemic heart disease: RR, 0.76 (95% CI, 0.6–0.95; P = .02).
  - Endometrial cancer: RR, 1.74 (95% CI, 1.30–2.34; P = .0002). Notably, the cumulative risk of endometrial cancer during years 5 to 14 from breast cancer diagnosis was 3.1% for women who received 10 years of tamoxifen versus 1.6% for women who received 5 years of tamoxifen. The mortality rate for years 5 to 14 was 12.2% for women who received 10 years of tamoxifen versus 15% for women who received 5 years of tamoxifen, for an absolute mortality reduction of 2.8%.

Aromatase Inhibitors

Patients on tamoxifen more frequently developed endometrial cancer and cerebrovascular accidents, whereas patients on anastrozole had more fracture episodes. The frequency of myocardial infarction was similar in both groups. Except for a continued increased frequency of endometrial cancer in the tamoxifen group, these differences did not persist in the posttreatment period.[17]

### References

Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823
Wolff AC, Blackford AL, Visvanathan K, et al.: Risk of marrow neoplasms after adjuvant breast cancer therapy: the national comprehensive cancer network experience. J Clin Oncol 33 (4): 340-8, 2015.25534386
Piccart-Gebhart MJ, Procter M, Leyland-Jones B, et al.: Trastuzumab after adjuvant chemotherapy in HER2-positive breast cancer. N Engl J Med 353 (16): 1659-72, 2005.16236737
Tan-Chiu E, Yothers G, Romond E, et al.: Assessment of cardiac dysfunction in a randomized trial comparing doxorubicin and cyclophosphamide followed by paclitaxel, with or without trastuzumab as adjuvant therapy in node-positive, human epidermal growth factor receptor 2-overexpressing breast cancer: NSABP B-31. J Clin Oncol 23 (31): 7811-9, 2005.16258083
Slamon D, Eiermann W, Robert N, et al.: BCIRG 006: 2nd interim analysis phase III randomized trial comparing doxorubicin and cyclophosphamide followed by docetaxel (AC->T) with doxorubicin and cyclophosphamide followed by docetaxel and trastuzumab (AC->TH) with docetaxel, carboplatin and trastuzumab (TCH) in Her2neu positive early breast cancer patients. [Abstract] 29th Annual San Antonio Breast Cancer Symposium, December 14-17, 2006, San Antonio, Texas. A-52, 2006.
Joensuu H, Kellokumpu-Lehtinen PL, Bono P, et al.: Adjuvant docetaxel or vinorelbine with or without trastuzumab for breast cancer. N Engl J Med 354 (8): 809-20, 2006.16495393
Lenihan D, Suter T, Brammer M, et al.: Pooled analysis of cardiac safety in patients with cancer treated with pertuzumab. Ann Oncol 23 (3): 791-800, 2012.21665955
Valachis A, Nearchou A, Polyzos NP, et al.: Cardiac toxicity in breast cancer patients treated with dual HER2 blockade. Int J Cancer 133 (9): 2245-52, 2013.23629633
Davies C, Pan H, Godwin J, et al.: Long-term effects of continuing adjuvant tamoxifen to 10 years versus stopping at 5 years after diagnosis of oestrogen receptor-positive breast cancer: ATLAS, a randomised trial. Lancet 381 (9869): 805-16, 2013.23219286
Howell A, Cuzick J, Baum M, et al.: Results of the ATAC (Arimidex, Tamoxifen, Alone or in Combination) trial after completion of 5 years' adjuvant treatment for breast cancer. Lancet 365 (9453): 60-2, 2005.15639680

## Posttherapy Surveillance of Stages I, II, and III Breast Cancer

The frequency of follow-up and the appropriateness of screening tests after the completion of primary treatment for stage I, stage II, or stage III breast cancer remain controversial.

Evidence from randomized trials indicates that periodic follow-up with bone scans, liver sonography, chest x-rays, and blood tests of liver function does not improve survival or quality of life when compared with routine physical examinations.[1-3] Even when these tests permit earlier detection of recurrent disease, patient survival is unaffected.[2] On the basis of these data, acceptable follow-up can be limited to the following for asymptomatic patients who complete treatment for stages I to III breast cancer:

- Physical examination.
- Annual mammography.

### References

Impact of follow-up testing on survival and health-related quality of life in breast cancer patients. A multicenter randomized controlled trial. The GIVIO Investigators. JAMA 271 (20): 1587-92, 1994.8182811 94238759
Rosselli Del Turco M, Palli D, Cariddi A, et al.: Intensive diagnostic follow-up after treatment of primary breast cancer. A randomized trial. National Research Council Project on Breast Cancer follow-up. JAMA 271 (20): 1593-7, 1994.7848404 94238760
Khatcheressian JL, Wolff AC, Smith TJ, et al.: American Society of Clinical Oncology 2006 update of the breast cancer follow-up and management guidelines in the adjuvant setting. J Clin Oncol 24 (31): 5091-7, 2006.17033037

## Treatment of Locoregional Recurrent Breast Cancer

Recurrent breast cancer often responds to therapy, although treatment is rarely curative at this stage of disease. Patients with locoregional breast cancer recurrence may become long-term survivors with appropriate therapy.

The rates of locoregional recurrence have declined over time, and a meta-analysis suggests a recurrence rate of less than 3% in patients treated with breast-conserving surgery and radiation therapy.[1] The rates are somewhat higher (up to 10%) for those treated with mastectomy.[2] Nine percent to 25% of patients with locoregional recurrence will have distant metastases or locally extensive disease at the time of recurrence.[3-5]

Before treatment for recurrent breast cancer, restaging to evaluate the extent of disease is indicated. Cytological or histological documentation of recurrent disease is obtained whenever possible. When therapy is selected, the estrogen-receptor (ER) status, progesterone-receptor (PR) status, and human epidermal growth factor receptor 2 (HER2) status at the time of recurrence and previous treatment are considered, if known.

ER status may change at the time of recurrence. In a single small study by the Cancer and Leukemia Group B (MDA-MBDT-8081), 36% of hormone receptor–positive tumors were found to be receptor negative in biopsy specimens isolated at the time of recurrence.[6] Patients in this study had no interval treatment. If ER and PR statuses are unknown, then the site(s) of recurrence, disease-free interval, response to previous treatment, and menopausal status are useful in the selection of chemotherapy or hormone therapy.[7]

Patients with locoregional recurrence should be considered for further local treatment (e.g., mastectomy). In one series, the 5-year actuarial rate of relapse for patients treated for invasive recurrence after initial breast conservation and radiation therapy was 52%.[4]

Treatment options also depend on the site of recurrence, as follows:

- Chest wall: Local chest wall recurrence after mastectomy is often a sign of widespread disease, but, in a subset of patients, it may be the only site of recurrence. For patients in this subset, surgery and/or radiation therapy may be curative.[8,9] Patients with chest wall recurrences of less than 3 cm, axillary and internal mammary node recurrence (not supraclavicular, which has a poorer survival), and a greater-than-2-year disease-free interval before recurrence have the best chance for prolonged survival.[9] The 5-year disease-free survival (DFS) rate in one series of such patients was 25%, with a 10-year rate of 15%.[10] The locoregional control rate was 57% at 10 years. Systemic therapy should be considered in patients with locoregional recurrence.
- Breast: In the Chemotherapy as Adjuvant for Locally Recurrent Breast Cancer (CALOR (https://www.cancer.gov/clinicaltrials/NCT00074152) [NCT00074152]) trial, patients with a history of breast-conserving surgery or mastectomy with clear margins and complete excision of an isolated local recurrence of their breast cancer were randomly assigned to receive either chemotherapy of the physician's choice or no chemotherapy. The study was closed early because of poor accrual. The original sample size for a hazard ratio (HR) of 0.74 was 977 patients (347 DFS events) and was revised subsequently to 265 patients (HR, 0.6; 124 DFS events), with only 162 enrolled at the time of study closure.[11][Level of evidence B1]
  - In ER-negative patients, the HR for DFS for chemotherapy versus no chemotherapy was 0.29 (95% confidence interval [CI], 0.13–0.67; 10-year DFS, 70% vs. 34%), whereas in ER-positive patients, the HR was 1.07 (95% CI, 0.57–2.00; 10-year DFS, 50% vs. 59%). The interaction between chemotherapy and ER status with respect to DFS was significant (P = .013).[12]
  - This trial supports consideration of adjuvant chemotherapy after complete resection of isolated locoregional recurrence of breast cancer in patients with ER-negative tumors.

All patients with recurrent breast cancer are considered candidates for ongoing clinical trials. For more information, see the Treatment of Metastatic Breast Cancer section.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Darby S, McGale P, Correa C, et al.: Effect of radiotherapy after breast-conserving surgery on 10-year recurrence and 15-year breast cancer death: meta-analysis of individual patient data for 10,801 women in 17 randomised trials. Lancet 378 (9804): 1707-16, 2011.22019144
Buchanan CL, Dorn PL, Fey J, et al.: Locoregional recurrence after mastectomy: incidence and outcomes. J Am Coll Surg 203 (4): 469-74, 2006.17000389
Aberizk WJ, Silver B, Henderson IC, et al.: The use of radiotherapy for treatment of isolated locoregional recurrence of breast carcinoma after mastectomy. Cancer 58 (6): 1214-8, 1986.3742446 86298068
Abner AL, Recht A, Eberlein T, et al.: Prognosis following salvage mastectomy for recurrence in the breast after conservative surgery and radiation therapy for early-stage breast cancer. J Clin Oncol 11 (1): 44-8, 1993.8418240 93115779
Haffty BG, Fischer D, Beinfield M, et al.: Prognosis following local recurrence in the conservatively treated breast cancer patient. Int J Radiat Oncol Biol Phys 21 (2): 293-8, 1991.2061106 91285928
Kuukasjärvi T, Kononen J, Helin H, et al.: Loss of estrogen receptor in recurrent breast cancer is associated with poor response to endocrine therapy. J Clin Oncol 14 (9): 2584-9, 1996.8823339 96420641
Perry MC, Kardinal CG, Korzun AH, et al.: Chemohormonal therapy in advanced carcinoma of the breast: Cancer and Leukemia Group B protocol 8081. J Clin Oncol 5 (10): 1534-45, 1987.3655856 88010110
Schwaibold F, Fowble BL, Solin LJ, et al.: The results of radiation therapy for isolated local regional recurrence after mastectomy. Int J Radiat Oncol Biol Phys 21 (2): 299-310, 1991.2061107 91285929
Halverson KJ, Perez CA, Kuske RR, et al.: Survival following locoregional recurrence of breast cancer: univariate and multivariate analysis. Int J Radiat Oncol Biol Phys 23 (2): 285-91, 1992.1587748 92267887
Halverson KJ, Perez CA, Kuske RR, et al.: Isolated local-regional recurrence of breast cancer following mastectomy: radiotherapeutic management. Int J Radiat Oncol Biol Phys 19 (4): 851-8, 1990.2211253 91008556
Aebi S, Gelber S, Anderson SJ, et al.: Chemotherapy for isolated locoregional recurrence of breast cancer (CALOR): a randomised trial. Lancet Oncol 15 (2): 156-63, 2014.24439313
Wapnir IL, Price KN, Anderson SJ, et al.: Efficacy of Chemotherapy for ER-Negative and ER-Positive Isolated Locoregional Recurrence of Breast Cancer: Final Analysis of the CALOR Trial. J Clin Oncol 36 (11): 1073-1079, 2018.29443653

## Treatment of Metastatic Breast Cancer

Treatment of metastatic disease is palliative in intent. Goals of treatment include prolonging life and improving quality of life. The 5-year relative survival rate for women with metastatic breast cancer is 31.9%.[1] The longest median survival outcomes have been observed in patients with human epidermal growth factor receptor 2 (HER2)-positive and hormone receptor–positive metastatic breast cancer, and less favorable outcomes have been observed in patients with metastatic triple-negative breast cancer (TNBC).[2]

### Treatment Option Overview for Metastatic Breast Cancer

Treatment options for metastatic breast cancer include:

1. Hormone therapy (tamoxifen, aromatase inhibitors, selective estrogen receptor [ER] degraders).
2. HER2-targeted therapy.
3. CDK4/6 inhibitors.
4. mTOR inhibitors.
5. PIK3CA inhibitors.
6. Chemotherapy.
7. Immunotherapy.
8. Surgery for patients with limited symptomatic metastases.
9. Radiation therapy for patients with limited symptomatic metastases.
10. Bone-modifying therapy for patients with bone metastases.

In many cases, these therapies are given in sequence and used in various combinations.

Cytological or histological documentation of metastatic disease, with testing of ER, progesterone receptor, and HER2 statuses, should be obtained at the time of metastatic presentation, if possible. If not possible, it is appropriate to consider liquid biopsy (via circulating tumor cell and/or circulating tumor DNA testing).

All patients with metastatic breast cancer are considered candidates for ongoing clinical trials.

### Metastatic HER2-Negative Hormone Receptor–Positive Breast Cancer

#### Endocrine therapy and cyclin-dependent kinase (CDK) inhibitor therapy

CDK4 and CDK6 have been implicated in the continued proliferation of hormone receptor–positive breast cancer resistant to endocrine therapy. CDK inhibitors have been approved by the U.S. Food and Drug Administration (FDA) in combination with endocrine therapy in both first-line and later-line treatment of advanced, HER2-negative hormone receptor–positive breast cancer. Three oral CDK4/6 inhibitors are currently available: palbociclib, ribociclib, and abemaciclib.

Overall, the addition of CDK4/6 inhibitors to endocrine therapy is associated with improved breast cancer outcomes and, in general, either maintained or improved quality of life.[3-8] This benefit was observed across multiple clinicopathological subgroups of breast cancer.[9]

##### First-line palbociclib and endocrine therapy

Evidence (first-line palbociclib and endocrine therapy):

1. PALOMA-2 (https://www.cancer.gov/clinicaltrials/NCT01740427) (NCT01740427) confirmed the results of the phase II PALOMA-1 trial.[10] This phase III, double-blind trial compared placebo plus letrozole with palbociclib plus letrozole as initial therapy for ER-positive postmenopausal patients with advanced disease (n = 666). The primary end point was investigator-assessed progression-free survival (PFS).[11]
  - The median PFS was 24.8 months in the palbociclib-plus-letrozole group compared with 14.5 months in the placebo-plus-letrozole group (hazard ratio [HR], 0.58; 95% confidence interval [CI], 0.46–0.72; P < .001).[11][Level of evidence B1]
  - Overall survival (OS) data are not yet mature.
  - Patients who received palbociclib experienced more frequent cytopenias (66.4% grade 3 to 4 in palbociclib-treated patients vs. 1.4% in placebo-treated patients). Other common adverse events included nausea, arthralgia, fatigue, and alopecia. The most common grade 3 to 4 adverse events other than neutropenia included leukopenia (24.8% vs. 0%), anemia (5.4% vs. 1.8%), and fatigue (1.8% vs. 0.5%).

##### First-line ribociclib and endocrine therapy

Ribociclib, another CDK4/6 inhibitor, has also been tested in the first-line setting for postmenopausal patients and premenopausal patients with HER2-negative hormone receptor–positive, recurrent or metastatic breast cancer.

Evidence (first-line ribociclib and endocrine therapy):

1. The phase III placebo-controlled MONALEESA-2 (https://www.cancer.gov/clinicaltrials/NCT01958021) trial (NCT01958021) randomly assigned 668 patients to receive either first-line ribociclib plus letrozole or placebo plus letrozole.[12,13]
  - The primary end point (investigator-assessed PFS) was met. A preplanned interim analysis was performed after 243 patients had disease progression or died, and median duration of follow-up was 15.3 months. After 18 months, the PFS rate was 63.0% (95% CI, 54.6%–70.3%) in the ribociclib group and 42.2% (95% CI, 34.8%–49.5%) in the placebo group.[12]
  - OS was a secondary end point. A protocol-specified final analysis of OS was published after 400 deaths and a median follow-up of 6.6 years. Patients who received ribociclib plus letrozole had a significant OS benefit compared with patients who received placebo plus letrozole. Median OS was 63.9 months in the ribociclib group and 51.4 months in the placebo group (HR_death_, 0.76; 95% CI, 0.63–0.93; two-sided P = .008).[14][Level of evidence A1]
  - Grade 3 to 4 neutropenia occurred in 63.8% of patients in the ribociclib group and 1.2% of patients in the placebo group. Grade 1 to 2 nausea, infection, fatigue, and diarrhea were also noted. Grade 3 to 4 hepatobiliary toxic effects occurred in 14.4% of patients who received ribociclib and 4.8% of patients who received placebo. Prolonged QTcF interval occurred in 4.5% of patients in the ribociclib group and 2.1% of patients in the placebo group.
2. Ribociclib has also been tested in combination with fulvestrant in postmenopausal patients with HER2-negative hormone receptor–positive, recurrent or metastatic breast cancer. The MONALEESA-3 (https://www.cancer.gov/clinicaltrials/NCT02422615) trial (NCT02422615) included patients receiving first-line or second-line therapy. This phase III, placebo-controlled trial randomly assigned 726 patients in a 2:1 ratio to receive ribociclib plus fulvestrant or placebo plus fulvestrant.[15]
  a. The primary end point (investigator-assessed PFS) was met. At the time of final analysis for PFS, the median PFS for the ribociclib group was 20.5 months versus 12.8 months in the placebo group (HR, 0.593; 95% CI, 0.480–0.732; P < .001).[15][Level of evidence B1]
  b. OS was superior in the ribociclib group (HR, 0.724; 95% CI, 0.568–0.924; P = .004). The result crossed the prespecified stopping boundary (P = .011) for superior efficacy. Results were similar in all subgroups.[16][Level of evidence A1]
  c. Adverse events were similar to those in other studies of CDK4/6 inhibitors.
    - Grade 3 to 4 neutropenia occurred in 53.4% of patients in the ribociclib group and 0.0% of patients in the placebo group.
    - The rate of febrile neutropenia was 1.0% in the ribociclib group and 0% in the placebo group.
    - An increase in QTcF interval of more than 60 milliseconds from baseline was observed in 6.5% of patients in the ribociclib arm and 0.4% in the placebo arm.
3. Ribociclib was also assessed in the first-line setting in a study conducted solely in premenopausal or perimenopausal women receiving either tamoxifen or a nonsteroidal aromatase inhibitor (AI) plus goserelin.[17] In the MONALEESA-7 (https://www.cancer.gov/clinicaltrials/NCT02278120) trial (NCT02278120), 672 premenopausal patients with HER2-negative hormone receptor–positive, recurrent or metastatic breast cancer, who had not received endocrine therapy for advanced disease, were randomly assigned in a 1:1 ratio to ribociclib or placebo.
  a. The primary end point (investigator-assessed PFS) was met. At the time of final analysis for PFS, the median PFS for the ribociclib group was 23.8 months versus 13.0 months in the placebo group (HR, 0.55; 95% CI, 0.44–0.69; P < .0001).[17][Level of evidence A3]
  b. OS was a secondary end point. The combination of ribociclib plus endocrine therapy was associated with longer OS than was endocrine therapy alone (42-month OS, 70.2% vs. 46%; HR_death_, 0.71; 95% CI, 0.54−0.95; P = .01).[18][Level of evidence A1] The survival benefit was observed both in patients who received an AI plus goserelin and in those who received tamoxifen, but it was not statistically significant in the much-smaller tamoxifen group.
  c. Adverse events were similar to those in other studies of CDK4/6 inhibitors.
    - Grade 3 to 4 neutropenia occurred in 61% of patients in the ribociclib group and 4% of patients in the placebo group.
    - The rate of febrile neutropenia was 2.0% in the ribociclib group and 1.0% in the placebo group.
    - An increase in QTcF interval of more than 60 milliseconds from baseline was observed in 10.0 % of patients in the ribociclib arm and 2.0% in the placebo arm. Sixty-millisecond increases were more common in patients receiving tamoxifen (16% on ribociclib and 7% on placebo).

##### First-line abemaciclib and endocrine therapy

Abemaciclib, another CDK4/6 inhibitor, has also been tested in the first-line setting for postmenopausal patients with HER2-negative hormone receptor–positive, recurrent or metastatic breast cancer.

Evidence (first-line abemaciclib and endocrine therapy):

1. MONARCH 3 (https://www.cancer.gov/clinicaltrials/NCT02246621) (NCT02246621) was a randomized, double-blind, phase III trial that evaluated first-line abemaciclib or placebo plus a nonsteroidal AI in 493 postmenopausal women with HER2-negative hormone receptor–positive, advanced breast cancer.[19]
  - The primary end point, investigator-assessed PFS, was met. After a median follow-up of 17.8 months, the PFS was not reached in the abemaciclib arm and was reached at 14.7 months in the placebo arm (HR, 0.54; 95% CI, 0.41–0.72; P = .000021).
  - In the final analysis of OS, there was a nonsignificant difference in median survival (median OS, 66.8 months [abemaciclib arm] vs. 53.7 months [placebo arm]; HR, 0.804; 95% CI, 0.637–1.015; P = .066).[20][Level of evidence B1]
  - The side effect profile of abemaciclib differs from the other CDK4/6 inhibitors. Diarrhea was the most frequent adverse event in the abemaciclib arm, although most of the diarrhea cases were grade 1.
  - Neutropenia was more common in the abemaciclib arm; however, only 21.1% of participants experienced grade 3 to 4 neutropenia.

##### Second-line palbociclib and endocrine therapy

Evidence (second-line palbociclib and endocrine therapy):

1. PALOMA-3 (https://www.cancer.gov/clinicaltrials/NCT01942135) (NCT01942135) was a double-blind, phase III trial of 521 patients with HER2-negative hormone receptor–positive, advanced breast cancer who had relapsed after or progressed on previous endocrine therapy and were randomly assigned to receive either fulvestrant plus placebo or fulvestrant plus palbociclib. Premenopausal and postmenopausal patients were eligible. Premenopausal patients received goserelin.[5][Level of evidence A3]
  - The final PFS analysis showed a median PFS of 9.5 months on the palbociclib-fulvestrant arm versus 4.6 months on the placebo-fulvestrant arm (HR, 0.46; 95% CI, 0.36–0.59; P < .0001).[21][Level of evidence A3]
  - Cytopenias, particularly neutropenia, were much more frequent on the palbociclib-containing arm, but febrile neutropenia was very uncommon (1%) in both groups. Patients receiving palbociclib had more-frequent fatigue, nausea, and headache.
  - A prespecified analysis of OS was made after 310 patients had died. A 6.9 month difference in median OS favoring the palbociclib-fulvestrant arm (34.9 months vs. 28.0 months) was found, which did not reach statistical significance (HR, 0.81; 95% CI, 0.64–1.03; P = .09).[22]
  - In a preplanned subgroup analysis, improved OS was observed in patients who had demonstrated sensitivity to hormone therapy (HR, 0.72; 95% CI, 0.55−0.94), whereas in patients without sensitivity, OS was not improved in the palbociclib group (HR, 1.14; 95% CI, 0.71−1.84; P = .12 for interaction).

##### Second-line ribociclib and endocrine therapy

The MONALEESA-3 trial included patients receiving second-line therapy. For more information, see the evidence on first-line ribociclib and endocrine therapy above.

##### Second-line abemaciclib and endocrine therapy

Evidence:

1. The MONARCH 2 (https://www.cancer.gov/clinicaltrials/NCT02107703) study (NCT02107703) tested abemaciclib (CDK4/6 inhibitor) in a phase III, placebo-controlled trial that randomly assigned 669 patients with HER2-negative, hormone receptor–positive, advanced breast cancer (with previous progression on endocrine therapy) to receive abemaciclib plus fulvestrant or placebo plus fulvestrant.[23]
  a. The primary end point (investigator-assessed PFS) was met, with median duration of follow-up of 19.5 months. The median PFS was 16.4 months for the abemaciclib-fulvestrant arm versus 9.3 months for the placebo-fulvestrant arm (HR, 0.55; 95% CI, 0.45–0.68; P < .001).[23][Level of evidence B1]
  b. OS data are mature and demonstrate an improvement in OS for patients receiving abemaciclib, and showed a median OS of 46.7 months for abemaciclib plus fulvestrant versus 37.3 months for placebo (HR, 0.757; 95% CI, 0.606–0.945; P = .01).[24][Level of evidence A1]
  c. Adverse events included diarrhea in the abemaciclib group (86.4%) and in the placebo group (24.7%), neutropenia (46% and 4%), nausea (45.1% and 22.9%), fatigue (39.9% and 26.9%), and abdominal pain (35.4% and 15.7%).
    - These events were mostly grade 1 to 2. Grade 1 to 2 diarrhea occurred in 73% of the patients in the abemaciclib group and in 24.2% of the placebo group. Anti-diarrheal medicine effectively managed this symptom in most cases, according to the study report.
    - Grade 3 diarrhea occurred in 13.4% of patients in the abemaciclib group and 0.4% of patients in the placebo group. No grade 4 diarrhea was reported.
    - Grade 3 to 4 neutropenia occurred in 25.5% of patients in the abemaciclib group and 1.7% of patients in the placebo group. Febrile neutropenia was reported in six patients in the abemaciclib arm.

##### CDK inhibitor therapy after disease progression on a prior CDK inhibitor

Evidence (CDK inhibitor therapy after disease progression on a prior CDK inhibitor):

1. The global, double-blind, placebo-controlled postMONARCH (https://www.cancer.gov/clinicaltrials/NCT05169567) trial (NCT05169567), reported in abstract form, included 368 patients with HER2-negative ER-positive advanced breast cancer. Patients were randomly assigned in a 1:1 ratio to receive either abemaciclib plus fulvestrant or fulvestrant alone. Eligible patients had (1) disease progression during initial therapy for metastatic breast cancer, which included a CDK4/6 inhibitor and aromatase inhibitor (99% of patients), or (2) disease relapse during or after adjuvant therapy for early breast cancer with a CDK4/6 inhibitor plus endocrine therapy. The CDK inhibitor was palbociclib in 59% of patients, ribociclib in 33% of patients, and abemaciclib in 8% of patients. No other prior treatment was permitted for metastatic disease. The primary end point was investigator-assessed PFS.[25]
  - The 6-month PFS rate was 50% in the abemaciclib-plus-fulvestrant group and 37% in the fulvestrant-alone group (HR, 0.73; 95% CI, 0.57–0.95).[25][Level of evidence B1]
  - Overall response rate, a secondary end point, was 17% in the abemaciclib-plus-fulvestrant group and 7% in the fulvestrant-alone group.

##### Single-agent CDK inhibitor therapy

Evidence (single-agent CDK inhibitor therapy):

1. Single-agent abemaciclib was approved by the FDA for use in HER2-negative hormone receptor–positive breast cancer with disease progression on or after endocrine therapy and chemotherapy on the basis of results of the MONARCH 1 (https://www.cancer.gov/clinicaltrials/NCT02102490) trial (NCT02102490).[26] Abemaciclib is the only CDK4/6 inhibitor approved as a single agent. MONARCH 1 was a single-arm phase II study of single-agent abemaciclib in 132 women with HER2-negative hormone receptor–positive, advanced breast cancer that had progressed on at least one line of previous endocrine therapy and at least two lines of previous chemotherapy. The study population was heavily pretreated, and most participants had visceral disease. Patients who had previous CDK inhibitors were excluded. The primary end point was investigator-assessed objective response rate.
  - The objective response rate was 19.7% at 12 months (95% CI, 13.3%–27.5%).
  - The clinical benefit rate was 42.4%.
  - Median PFS was 6.0 months (95% CI, 4.2–7.5).
  - The most common adverse event was diarrhea, which occurred in 90.2% of the participants. However, the majority was grade 1 to 2, and only 19.7% of participants experienced grade 3 diarrhea. There was no grade 4 diarrhea.
  - Neutropenia occurred in 97.7% of participants; however, the majority was grade 1 to 2, and only 26.9% of participants experienced grade 3 to 4 neutropenia.

#### Mammalian target of rapamycin (mTOR) inhibitor therapy plus endocrine therapy

Preclinical models and clinical studies suggest that mTOR inhibitors might overcome endocrine resistance.

Evidence (mTOR inhibitor therapy):

1. The Breast Cancer Trial of Oral Everolimus (BOLERO-2 (https://www.cancer.gov/clinicaltrials/NCT00863655) [NCT00863655]) was a randomized, phase III, placebo-controlled trial in which patients with hormone receptor–positive metastatic breast cancer that is resistant to nonsteroidal aromatase inhibition were randomly assigned to receive either the mTOR inhibitor everolimus plus exemestane, or placebo plus exemestane.[27][Level of evidence B1]
  - At the interim analysis, median PFS was 6.9 months for everolimus plus exemestane and 2.8 months for placebo plus exemestane (HR, 0.43; 95% CI, 0.35–0.54; P < .001).
  - The addition of everolimus to exemestane was more toxic than was placebo plus exemestane, with the most-common grade 3 or 4 adverse events being stomatitis (8% vs. 1%), anemia (6% vs. <1%), dyspnea (4% vs. 1%), hyperglycemia (4% vs. <1%), fatigue (4% vs. 1%), and pneumonitis (3% vs. 0%).
  - OS differences were not significant after further follow-up.[28]
2. TAMRAD (https://www.cancer.gov/clinicaltrials/NCT01298713) (NCT01298713) was an open-label, randomized, phase II trial comparing tamoxifen with tamoxifen plus everolimus in postmenopausal women whose disease had progressed after receiving an AI in the adjuvant or metastatic setting. The trial randomly assigned 57 women to receive tamoxifen and 54 women to receive the combination therapy.[29]
  - Median time to progression was 8.6 months in the combination group and 4.5 months in the tamoxifen group (HR, 0.54; 95% CI, 0.56−0.81; P = .002).
  - Toxicities were greater on the everolimus arm and similar to those in the BOLERO2 trial.
  - In an exploratory analysis, OS was 32.9 months in the tamoxifen group and not reached in the combination group (HR, 0.45; 95% CI, 0.24−0.81; P = .007).[29][Level of evidence A1]
3. PrE0102 (https://www.cancer.gov/clinicaltrials/NCT01797120) (NCT01797120) was a double-blind, randomized, phase II trial comparing fulvestrant with fulvestrant plus everolimus in postmenopausal women whose disease had progressed after receiving an AI in the adjuvant or metastatic setting. Sixty-six women were randomly assigned to the combination arm and 65 to fulvestrant alone.[30]
  - Median PFS was 10.3 months on the combination arm and 5.1 months on the fulvestrant-alone arm (HR, 0.61; 95% CI, 0.40−0.92; P = .02).[30][Level of evidence B1]
  - Toxicities were similar to those in previous studies.
  - The was no observed difference in OS between the arms.
4. The single-arm SWISH (https://www.cancer.gov/clinicaltrials/NCT02069093) trial (NCT02069093) assessed the efficacy of a dexamethasone oral solution (0.5 mg per 5 mL) in the prevention of stomatitis in women receiving exemestane plus everolimus.[31] The incidence of grade 2 or worse stomatitis was 2% in the 85 evaluable patients in this study compared with 33% in the BOLERO-2 trial.

#### AKT inhibitor therapy

Activating AKT1 variants are found in 5% to 10% of advanced breast cancers. AKT is downstream from both PIK3CA and PTEN in the PIK3CA/AKT/PTEN pathway.

##### Capivasertib

Overactivation of the PIK3CA/AKT/PTEN signaling pathway occurs in approximately one-half of HER2-negative hormone receptor–positive breast cancers. Activating PIK3CA and AKT1 variants and inactivating alterations in PTEN can cause this overactivation. Capivasertib is an oral small-molecule inhibitor of all three AKT isoforms (AKT1, AKT2, and AKT3).

Evidence (capivasertib):

1. The phase III, randomized, double-blind CAPITELLO-291 (https://www.cancer.gov/clinicaltrials/NCT04305496) trial (NCT04305496) enrolled women and men with HER2-negative ER-positive advanced breast cancer. Patients had disease relapse or progression during or after treatment with an aromatase inhibitor, with or without previous CDK4/6 inhibitor therapy. The trial included 708 patients: 289 patients (40.8%) had PIK3CA/AKT/PTEN pathway alterations and 489 (69.1%) received a prior CDK4/6 inhibitor for advanced breast cancer. Patients were randomly assigned in a 1:1 ratio to receive either capivasertib plus fulvestrant or placebo plus fulvestrant. The dual primary end point was investigator-assessed PFS which was measured both in the overall population and in patients with PIK3CA/AKT/PTEN pathway–altered tumors.[32]
  - In the overall population, the median PFS was 7.2 months in the capivasertib-fulvestrant group versus 3.6 months in the placebo-fulvestrant group (HR, 0.60; 95% CI, 0.51–0.71; P < .001).[32][Level of evidence B1]
  - In the PIK3CA/AKT/PTEN pathway-altered population, the median PFS was 7.3 months in the capivasertib-fulvestrant group and 3.1 months in the placebo-fulvestrant group (HR, 0.50; 95% CI, 0.38–0.65; P < .001).
  - In patients who received capivasertib and fulvestrant, the most frequent grade 3 or higher adverse events were rash (12.1%) and diarrhea (9.3%). Grade 3 or higher rash and diarrhea occurred in 0.3% of patients who received placebo and fulvestrant. Adverse events sometimes led to treatment discontinuation. This occurred in 13.0% of the capivasertib-fulvestrant group and 2.3% of the placebo-fulvestrant group.

Based on this trial, the FDA approved capivasertib in 2023.

#### Alpelisib plus endocrine therapy

Activating PIK3CA variants are identified in approximately 40% of HER2-negative hormone receptor–positive breast cancers. Alpelisib is an alpha-specific PIK3CA inhibitor.

Evidence (alpelisib plus endocrine therapy):

1. SOLAR-1 (https://www.cancer.gov/clinicaltrials/NCT02437318) (NCT02437318) was a randomized phase III trial comparing alpelisib plus fulvestrant with placebo plus fulvestrant. The trial included 572 postmenopausal women with HER2-negative hormone receptor–positive advanced breast cancer who had received previous endocrine therapy.[33][Level of evidence B1]
  PIK3CA variants were confirmed in 341 participants. The primary end point was PFS in the cohort of patients with PIK3CA variants.
  - In this cohort, median PFS was 11 months in the alpelisib-plus-fulvestrant arm compared with 5.7 months in the placebo-plus-fulvestrant arm (HR_progression_ or HR_death_, 0.65; 95% CI, 0.50−0.85; P < .001).
  - PFS did not differ between arms in the cohort of participants without PIK3CA variants (median PFS, 7.4 months in the alpelisib-plus-fulvestrant arm vs. 5.6 months in the placebo-plus-fulvestrant arm).
  - OS in the cohort with PIK3CA variants was a secondary end point. OS data are not yet mature.
  - Very few study participants had received previous CDK4/6 inhibitor therapy.
  - Common toxicities associated with alpelisib included hyperglycemia, diarrhea, nausea, anorexia, and rash. Careful monitoring and management of hyperglycemia are required during alpelisib use.
  The FDA approved alpelisib for use in combination with fulvestrant in advanced PIK3CA-mutated, HER2-negative hormone receptor–positive breast cancer after previous endocrine therapy.

#### Elacestrant

Elacestrant is an oral selective ER degrader (SERD). It degrades ER alpha in a dose-dependent manner and inhibits estradiol-dependent ER-directed gene transcription and tumor growth, including in cells with ESR1 variants. ESR1 variants result in estrogen-independent ER activation and, consequently, resistance to AIs, but not necessarily to SERDs and selective ER modulators.

Evidence (elacestrant):

1. A randomized, open-label, phase III trial (EMERALD (https://www.cancer.gov/clinicaltrials/NCT03778931) [NCT03778931]) enrolled patients with ER-positive HER2-negative metastatic breast cancer. Eligible patients had previously received one or two lines of endocrine therapy, a CDK4/6 inhibitor, and no more than one line of chemotherapy. A total of 477 patients were randomly assigned in a 1:1 ratio to receive either elacestrant 400 mg orally once daily or standard-of-care endocrine monotherapy. Primary end points were PFS by blinded independent central review in all patients and in patients with detectable ESR1 variants. ESR1 variants were found in 47.8% of patients, and 43.4% of patients had received two prior endocrine therapies. Twenty-nine percent of patients in the elacestrant arm and 31% of patients in the standard-of-care arm had received prior fulvestrant therapy. Less than 5% of patients in either arm had received prior mTOR inhibitor therapy.[34]
  - PFS was prolonged in the elacestrant arm in all patients (HR, 0.70; 95% CI, 0.55–0.88; P = .002) and in elacestrant-treated patients with ESR1 variants (HR, 0.55; 95% CI, 0.39–0.77; P = .0005). Among all patients, 6-month PFS rates were 34.3% for patients in the elacestrant arm and 20.4% for patients in the standard-of-care arm. In patients with ESR1 variants, 6-month PFS rates were 40.8% for patients in the elacestrant arm and 19.1% for patients in the standard-of-care arm. Similarly, for all patients, 12-month PFS rates were 22.3% for patients in the elacestrant arm and 9.4% for patients in the standard-of-care arm. For patients with ESR1 variants, 12-month PFS rates were 26.8% for patients in the elacestrant arm and 8.2% for patients in the standard-of-care arm.[34][Level of evidence B1]
  - The most common adverse events observed with elacestrant versus standard-of-care therapy included nausea (35.0% vs. 18.8%), fatigue (19.0% vs. 18.8%), vomiting (19.0% vs. 8.3%), decreased appetite (14.8% vs. 9.2%), and arthralgia (14.3% vs. 16.2%). Grade 3 or 4 adverse events occurred in 64 patients (27.0%) who received elacestrant and 47 patients (20.5%) who received standard-of-care therapy. The most common grade 3 or 4 adverse events in the elacestrant arm were nausea (six patients, 2.5%), back pain (six patients, 2.5%), and increased alanine aminotransferase (five patients, 2.1%). The most common grade 3 or 4 adverse events in the standard-of-care arm were nausea, fatigue, diarrhea, and increased aspartate aminotransferase (each occurring in two patients, 0.9%). Adverse events led to treatment discontinuation in 15 patients (6.3%) in the elacestrant arm and 10 patients (4.4%) in the standard-of-care arm.

#### HDAC inhibitor therapy

Epigenetic modification alters gene expression. This can lead to endocrine therapy resistance and may be reversed by epigenetic modifiers such as histone deacetylase (HDAC) inhibitors. Entinostat, an oral HDAC inhibitor, induces downregulation of estrogen-independent growth factor signaling pathways and normalization of estrogen receptor levels. Entinostat was evaluated in a phase III trial and showed no benefit.[35,36]

#### Endocrine therapy alone

With the PFS and OS advantages associated with combination therapy with targeted agents and endocrine therapy as discussed above, single-agent endocrine therapy is less frequently used, especially in the first-line setting. However, its use remains appropriate in select cases as first-line therapy and in later-line therapy after progression on targeted therapies and before the use of chemotherapy in cases in which endocrine-sensitive disease is still thought to be present.

Commonly used single-agent endocrine therapies include tamoxifen, nonsteroidal AI (letrozole, anastrozole), the steroidal AI exemestane, and fulvestrant. In general, premenopausal women with metastatic breast cancer undergo ovarian suppression or ablation and are treated in the same manner as postmenopausal women.

##### Tamoxifen and AI therapy

While tamoxifen has been used for many years in treating postmenopausal women with newly metastatic disease that is ER positive, PR positive, or ER/PR unknown, several randomized trials suggest equivalent or superior response rates and PFS for AIs compared with tamoxifen.[37-39][Level of evidence B1]

Evidence (tamoxifen and AI therapy):

1. A meta-analysis evaluated patients with metastatic disease who were randomly assigned to receive either an AI as their first or second hormone therapy, or standard therapy (tamoxifen or a progestational agent).[40][Level of evidence A1]
  - Patients who received an AI as either their first or second hormone therapy for metastatic disease and were randomly assigned to receive a third-generation drug (anastrozole, letrozole, exemestane, or vorozole) lived longer (HR_death_, 0.87; 95% CI, 0.82–0.93) than those who received standard therapy (tamoxifen or a progestational agent).

##### Fulvestrant

Fulvestrant is a selective estrogen receptor degrader that has been studied in the first-line and second-line setting in women with advanced or metastatic breast cancer.

###### First-line fulvestrant

Evidence (first-line fulvestrant):

1. FALCON (https://www.cancer.gov/clinicaltrials/NCT01602380) (NCT01602380) was a phase III, double-blind, randomized trial that compared fulvestrant (500 mg) with anastrozole (1 mg) in patients with advanced or metastatic receptor-positive breast cancer who had not received previous endocrine therapy.[41] The trial randomly assigned 230 patients to receive fulvestrant and 232 patients to receive anastrozole.
  - Median PFS was 16.6 months in the fulvestrant group and 13.8 months in the anastrozole group (HR, 0.797; 95% CI, 0.637−0.999; P = .049).[41][Level of evidence B1]
  - The frequency of adverse events was similar in the two groups, and there was no difference in quality of life.
  - OS results were not reported.

###### Second-line fulvestrant

Evidence (second-line fulvestrant):

1. Two randomized trials that enrolled 400 and 451 patients whose disease had progressed after they received tamoxifen demonstrated that fulvestrant yielded results similar to those of anastrozole in terms of its impact on PFS.[42,43] The proper sequence of these therapies is not known.[44,45]
2. EFECT (https://www.cancer.gov/clinicaltrials/NCT00065325) (NCT00065325) was a phase III, double-blind, randomized trial that compared fulvestrant given in a loading-dose regimen (500 mg day 0, 250 mg days 14 and 28, and 250 mg every 28 days thereafter) with exemestane (25 mg) in women who had developed progressive disease after previous nonsteroidal AI (anastrozole or letrozole) therapy.[46] The trial randomly assigned 351 women to receive fulvestrant and 342 women to receive exemestane.
  - Median time to progression was 3.7 months in both groups (HR, 0.93; 95% CI, 0.819−1.133; P = .65).[46][Level of evidence B1]
  - The frequency of adverse events was similar in both groups, and there was no difference in quality of life.
  - OS results were not reported.
3. CONFIRM (https://www.cancer.gov/clinicaltrials/NCT00099437) (NCT00099437) was a double-blind phase III trial that compared two doses of fulvestrant (500 mg vs. 250 mg, each given in a loading-dose schedule) in 736 women whose disease had progressed on previous endocrine therapy.[47]
  - PFS was significantly better on the higher-dose arm (HR, 0.80; 95% CI, 0.68–0.94; P = .006).[47][Level of evidence B1]
  - Adverse events and quality of life were similar on the two arms.

##### Combination endocrine therapy with an AI and fulvestrant

Conflicting results were found in two trials that compared the combination of the antiestrogen fulvestrant and anastrozole with anastrozole alone in the first-line treatment of hormone receptor–positive postmenopausal patients with recurrent or metastatic disease. For more information, see the Fulvestrant section.[48,49] In both studies, fulvestrant was given as a 500-mg loading dose on day 1; 250 mg was given on days 15 and 29, and monthly thereafter; plus, 1 mg of anastrozole was given daily. The Southwest Oncology Group (SWOG) trial included more patients who presented with metastatic disease; the Fulvestrant and Anastrozole Combination Therapy (FACT (https://www.cancer.gov/clinicaltrials/NCT00256698) [NCT00256698]) study enrolled more patients who had previously received tamoxifen.[48,49]

Evidence (combination endocrine therapy with an AI and fulvestrant):

1. The SWOG-0226 (https://www.cancer.gov/clinicaltrials/NCT00075764) trial (NCT00075764), which enrolled 707 patients, demonstrated a statistically significant difference in PFS (HR, 0.80; 95% CI, 0.68–0.94; P = .007) and OS (HR, 0.81; 95% CI, 0.65–1.00; P = .05).[48][Level of evidence A1]
2. In an analysis done after 5 more years of follow-up, the observed benefits of combined therapy were still present, and the level of significance with respect to OS was greater (HR, 0.82; 95% CI, 0.69–0.98; P = .03).[50][Level of evidence A1]
3. In contrast, the FACT trial, which enrolled 514 patients, found no difference in either disease-free survival (DFS) (HR, 0.99; 95% CI, 0.81–1.20; P = .91) or OS (HR, 1.0; 95% CI, 0.76–1.32; P = 1.00).[49][Level of evidence A1]

#### Sequencing therapy for hormone receptor–positive metastatic breast cancer

The optimal sequence of therapies for hormone receptor–positive metastatic breast cancer is not known. In general, in the absence of a visceral crisis, most patients receive sequential endocrine-based regimens before transitioning to chemotherapy. On the basis of the PFS and OS improvements mentioned above, a combination of a CDK4/6 inhibitor therapy and endocrine therapy in the first line is an appropriate choice.

##### Poly (ADP-ribose) polymerase (PARP) inhibitor therapy

Patients with hormone receptor-positive metastatic breast cancer and a germline BRCA variant are eligible for PARP inhibitor therapy. For more information, see the Germline BRCA-Mutated Metastatic Breast Cancer section.

#### Sacituzumab govitecan

Sacituzumab govitecan is an antibody-drug conjugate that combines an anti–trophoblast cell-surface antigen 2 (TROP2) antibody with an active metabolite of irinotecan (SN-38). TROP2 is a transmembrane calcium signal transducer highly expressed in HER2-negative ER-positive breast cancer. Internalization of TROP2–bound sacituzumab govitecan delivers SN-38 into the tumor cell through hydrolysis of the linker.[51]

Evidence (sacituzumab govitecan):

1. The global phase III TROPiCS-02 (https://www.cancer.gov/clinicaltrials/NCT03901339) trial (NCT03901339) randomly assigned 543 patients to receive either sacituzumab govitecan or physician’s choice chemotherapy (eribulin, vinorelbine, capecitabine, or gemcitabine). Patients had locally recurrent inoperable or metastatic breast cancer that was endocrine-resistant, chemotherapy-treated, hormone receptor–positive, and HER2-negative. Patients had received three median lines of chemotherapy for advanced disease, and 99% of patients had previously received a CDK4/6 inhibitor. The primary end point was PFS by blinded independent central review.[52][Level of evidence B1]
  - An analysis noted a 34% reduction in the risk of progression or death (HR, 0.66; 95% CI, 0.53–0.83; P = .0003). The median PFS was 5.5 months in the sacituzumab govitecan group and 4.0 months in the chemotherapy group. The PFS at 6 and 12 months was 46% and 21% for patients who received sacituzumab govitecan and 30% and 7% for patients who received chemotherapy.
  - Median OS data are not mature.
  - Key grade 3 or higher treatment-related adverse events were neutropenia (occurring in 51% of patients who received sacituzumab govitecan and 38% of patients who received chemotherapy) and diarrhea (occurring in 9% of patients who received sacituzumab govitecan and 1% of patients who received chemotherapy). One patient in the sacituzumab govitecan group died of a treatment-related adverse event (septic shock related to neutropenic colitis).
  - The objective response rate by blinded independent central review was 21% in the sacituzumab govitecan group and 14% in the chemotherapy group. The clinical benefit rate was higher with sacituzumab govitecan than with chemotherapy (34% vs. 22%).

The FDA has approved sacituzumab govitecan for patients with metastatic unresectable breast cancer, including patients with TNBC who have received at least two systemic therapies, including at least one for metastatic cancer. It is also approved in patients with HER2-negative hormone receptor–positive breast cancer who have received hormone therapy and at least two systemic therapies for metastatic cancer.

#### Chemotherapy

Chemotherapy may be appropriate for patients with HER2-negative hormone receptor–positive breast cancer. For more information, see the Chemotherapy for Metastatic Breast Cancer section.

### Metastatic HER2-Low Breast Cancer

Sixty percent of HER2-negative metastatic breast cancers express low levels of HER2, defined as a score of 1+ on immunohistochemical (IHC) analysis or as an IHC score of 2+ and negative results on in situ hybridization. These are referred to as HER2-low tumors. Historically, HER2-directed therapies have not improved outcomes in these patients. Early-phase trials of trastuzumab deruxtecan showed potential efficacy in this subgroup.[53] A subsequent randomized phase III trial showed OS benefit in this subgroup.[54] Trastuzumab deruxtecan is an antibody-drug conjugate consisting of a humanized anti-HER2 monoclonal antibody linked to a topoisomerase-I inhibitor payload through a cleavable linker. This agent offers bystander effect to surrounding HER2-low cells via uptake into HER2-amplified cells, intracellular cleavage of payload, and release of payload into the surrounding tumor.

Evidence (trastuzumab deruxtecan for HER2-low hormone receptor–positive and hormone receptor–negative tumors):

1. The DESTINY-Breast04 (https://www.cancer.gov/clinicaltrials/NCT03734029) trial (NCT03734029) randomly assigned 557 women in a 2:1 ratio to receive either trastuzumab deruxtecan or the physician’s choice of chemotherapy (capecitabine, eribulin, gemcitabine, paclitaxel, or nab-paclitaxel). Patients had received one or two prior lines of chemotherapy. The primary end point was PFS in the hormone receptor–positive group (88.7% of patients). The secondary end points were PFS in the total population, OS in the total population, and OS in the hormone receptor–positive group.[54][Level of evidence A1]
  - In the hormone receptor–positive cohort, the median PFS was 10.1 months for patients who received trastuzumab deruxtecan and 5.4 months for patients who received the physician’s choice of chemotherapy (HR_disease progression or death_, 0.51; P < .001). The OS was 23.9 months for patients who received trastuzumab deruxtecan and 17.5 months for patients who received the physician's choice of chemotherapy (HR_death_, 0.64; P = .003).
  - Among all patients, the median PFS was 9.9 months in the trastuzumab deruxtecan group and 5.1 months in the physician’s choice group (HR_disease progression or death_, 0.50; P < .001). The OS was 23.4 months in the trastuzumab deruxtecan group and 16.8 months in the physician's choice group (HR_death_, 0.64; P = .001).
  - Drug-related interstitial lung disease or pneumonitis occurred in 12.1% of the patients who received trastuzumab deruxtecan; 0.8% had grade 5 events.

1. The phase III, randomized, open-label DESTINY-Breast06 (https://www.cancer.gov/clinicaltrials/NCT04494425) trial (NCT04494425) included patients with ER-positive metastatic breast cancer with low HER2 expression (with a score of 1+ or 2+ on IHC analysis and negative results on in situ hybridization) or ultralow HER2 expression (with a score of 0 on IHC analysis with membrane staining). These patients previously received one or more lines of endocrine-based therapy and no previous chemotherapy for metastatic breast cancer. The trial randomly assigned 866 patients in a 1:1 ratio to receive either trastuzumab deruxtecan or the physician’s choice of chemotherapy. A total of 713 patients had HER2-low disease and 153 patients had HER2-ultralow disease. The primary end point was PFS.[55]
  - In patients with HER2-low disease, the median PFS was 13.2 months (95% CI, 11.4–15.2) in the trastuzumab deruxtecan group and 8.1 months (95% CI, 7.0–9.0) in the chemotherapy group (HR, 0.62; 95% CI, 0.51–0.74; P < .001).[55][Level of evidence B1]
  - Grade 3 or higher adverse events occurred in 52.8% of patients in the trastuzumab deruxtecan group and 44.4% of patients in the chemotherapy group. Interstitial lung disease occurred in 49 patients (11.3%; three events had grade 5 severity) and pneumonitis occurred in one patient (0.2%; grade 2).

Selection of this agent requires careful consideration and discussion between the clinician and patient about (1) the biology of the patient's disease, (2) the toxicity of the agent and risks to the patient compared with other standardly available agents, and (3) the cost of the agent and insurance coverage.

### Metastatic Triple-Negative Breast Cancer

#### Chemotherapy plus immunotherapy

The standard-of-care treatment for first-line metastatic TNBC with a programmed death-ligand 1 (PD-L1) combined positive score (CPS) of 10 or more is chemotherapy plus pembrolizumab. This was evaluated in the KEYNOTE-355 trial.[56,57]

##### Pembrolizumab

The phase III, randomized, placebo-controlled, double-blind, multinational KEYNOTE-355 (https://www.cancer.gov/clinicaltrials/NCT02819518) trial (NCT02819518) evaluated the addition of pembrolizumab to first-line chemotherapy in patients with metastatic TNBC. This combination was approved for use in this patient population as a result of the trial.[56,57]

Evidence (pembrolizumab):

1. Patients were randomly assigned in a 2:1 ratio to receive either pembrolizumab (200 mg every 3 weeks) and chemotherapy (nab-paclitaxel, paclitaxel, or gemcitabine plus carboplatin) or placebo and chemotherapy. Randomization was stratified by the type of on-study chemotherapy (taxane or gemcitabine/carboplatin), PD-L1 expression at baseline (CPS ≥1 or <1), and previous treatment with the same class of chemotherapy in the neoadjuvant or adjuvant setting (yes or no). Dual primary efficacy end points were PFS and OS assessed in the PD-L1 CPS of 10 or more, PD-L1 CPS of 1 or more, and ITT populations. Of the 847 patients assigned to treatment, 566 patients received pembrolizumab and chemotherapy and 281 patients received placebo and chemotherapy.[56,57]
  - At the second interim analysis, the median follow-up was 25.9 months in the pembrolizumab-and-chemotherapy group and 26.3 months in the placebo-and-chemotherapy group. Among patients with CPS of 10 or more, the median PFS was 9.7 months with pembrolizumab and chemotherapy and 5.6 months with placebo and chemotherapy (HR_progression or death_, 0.65; 95% CI, 0.49–0.86; one-sided P = .0012 [primary objective met]). Among patients with CPS of 1 or more, the median PFS was 7.6 months with pembrolizumab and chemotherapy and 5.6 months with placebo and chemotherapy (HR, 0.74; 0.61–0.90; one-sided P = .0014 [not significant]). Among the ITT population, the median PFS was 7.5 months and 5.6 months (HR, 0.82; 0.69–0.97 [not tested]). The pembrolizumab treatment effect increased with PD-L1 enrichment.
  - Based on the PFS data, the FDA approved pembrolizumab and chemotherapy for the treatment of patients with locally recurrent unresectable or metastatic TNBC whose tumors express PD-L1 (CPS ≥10).
  - At time of final analysis, the median follow-up was 44.1 months. In the group with a CPS of at least 10, the median OS was 23 months in the pembrolizumab-and-chemotherapy group and 16.1 months in the placebo-and-chemotherapy group (HR, 0.73; 95% CI, 0.55–0.95; two-sided P = .0185 [significant]). In the group with a CPS of at least 1, the median survival was not significantly altered (17.6 vs. 16 months; P = .1125).
  - Grade 3 to 5 treatment-related adverse events occurred in 68.1% of patients in the pembrolizumab group and 66.9% of patients in the placebo group. Two deaths occurred in the pembrolizumab group (acute kidney injury and pneumonia). There were no deaths in the placebo group. Grade 3 to 4 immune-mediated adverse events occurred in 5.3% of patients in the pembrolizumab group, none of which led to death.

##### Atezolizumab

The addition of atezolizumab, a PD-L1–positive antibody, to first-line chemotherapy for patients with HER2-negative hormone receptor–negative, advanced breast cancer was evaluated in the phase III, randomized, placebo-controlled IMpassion130 (https://www.cancer.gov/clinicaltrials/NCT02425891) trial (NCT02425891).[58,59] Participants (N = 902) were randomly assigned 1:1 to atezolizumab plus nanoparticle albumin-bound (nab)-paclitaxel or to placebo plus nab-paclitaxel. Participants were stratified according to the presence of liver metastases (yes/no), receipt of previous taxane therapy (yes/no), and PD-L1 status (positive or negative). PD-L1 expression of 1% or greater was defined as positive. Co-primary end points included PFS and OS, both of which were evaluated in the ITT population and in the PD-L1–positive population (n = 369).

Based on the initial publication of PFS data from IMPassion130, the FDA granted accelerated approval for the use of atezolizumab in combination with protein-bound paclitaxel for patients with unresectable locally advanced or metastatic TNBC whose tumors express PD-L1. However, a 2021 final analysis revealed no OS benefit in the ITT population.[58,59]

IMpassion131 (https://www.cancer.gov/clinicaltrials/NCT03125902) (NCT03125902) was a phase III, randomized, placebo-controlled, double-blind trial of first-line paclitaxel with or without atezolizumab for patients with unresectable locally advanced or metastatic TNBC. The study included 651 patients, 45% of whom had PD-L1–positive TNBC. This trial also did not demonstrate a benefit from the addition of atezolizumab to paclitaxel in this population.[60] Accordingly, the sponsor voluntarily withdrew this approval.

1. IMpassion130 reported PFS data with a median follow-up of 12.9 months.[58]
  - In the ITT population, PFS was improved with the addition of atezolizumab (median PFS, 7.2 months vs. 5.5 months; HR, 0.80; 95% CI, 0.69–0.92; P = .0025).
  - In the PD-L1–positive population, PFS was improved with the addition of atezolizumab (median PFS, 7.5 months vs. 5 months; HR, 0.62; 95% CI, 0.49–0.78; P < .001).
  - Adverse events occurred as expected. Adverse events that were potentially immune-related were more frequent in the atezolizumab arm.
2. The primary PFS analysis from IMpassion131 revealed that adding atezolizumab to paclitaxel did not improve investigator-assessed PFS in the PD-L1–positive population. The median PFS was 6.0 months for patients who received atezolizumab and paclitaxel compared with 5.7 months for patients who received placebo and paclitaxel (HR, 0.82; 95% CI, 0.60–1.12; P = .20).[60]
  - The final OS results showed no difference between the treatment arms. The median OS was 22.1 months for patients who received atezolizumab and paclitaxel compared with 28.3 months for patients who received placebo and paclitaxel in the PD-L1–positive population (HR, 1.11; 95% CI, 0.76–1.64).
  - Results in the ITT population were consistent with the PD-L1–positive population. The safety profile was consistent with known effects of each study drug.

#### Sacituzumab govitecan

Sacituzumab govitecan is an antibody-drug conjugate that combines an a TROP2 antibody with an active metabolite of irinotecan (SN-38). TROP2 is a transmembrane calcium signal transducer highly expressed in TNBC. Internalization of TROP2–bound sacituzumab govitecan delivers SN-38 into the tumor cell through hydrolysis of the linker.[51]

Evidence (sacituzumab govitecan):

1. In a phase I/II trial, 108 women with TNBC who received at least two previous chemotherapy regimens (median, three) were treated with sacituzumab govitecan at a dose of 10 mg/kg intravenously on days 1 and 8 of a 21-day cycle.[61][Level of evidence C3]
  - A response rate of 33.3% (95% CI, 24.6%–43.1%) was observed.
  - The median duration of response was 7.7 months (95% CI, 4.9–10.8).
  - The main toxicity was neutropenia, and four deaths occurred during treatment.[61][Level of evidence C3]
  - The FDA granted accelerated approval to sacituzumab govitecan for patients with metastatic TNBC after at least two previous lines of therapy.
2. A phase III randomized trial (ASCENT (https://www.cancer.gov/clinicaltrials/NCT02574455) [NCT02574455]) confirmed the efficacy of sacituzumab govitecan in patients with metastatic TNBC that was relapsed or refractory to two or more previous chemotherapy regimens. The trial randomly assigned 468 women without brain metastases to receive either sacituzumab govitecan or the physician's choice of single-agent chemotherapy (eribulin, vinorelbine, capecitabine, or gemcitabine). The primary end point was PFS. All patients had previous taxane exposure. Patients received sacituzumab govitecan at a dose of 10 mg/kg intravenously on days 1 and 8 of each 21-day cycle.[62]
  - In the chemotherapy arm, 54% of patients received eribulin, 20% received vinorelbine, 13% received capecitabine, and 12% received gemcitabine.
  - The median PFS was 5.6 months (95% CI, 4.3–6.3; 166 events) in the sacituzumab govitecan arm and 1.7 months (95% CI, 1.5–2.6; 150 events) in the chemotherapy arm (HR_disease progression or death_, 0.41; 95% CI, 0.32–0.52; P < .001).[62][Level of evidence A1]
  - The median OS was 12.1 months (95% CI, 10.7–14.0) in the sacituzumab govitecan arm and 6.7 months (95% CI, 5.8–7.7) in the chemotherapy arm (HR_death_, 0.48; 95% CI, 0.38–0.59; P < .001).
  - The overall response rate was 35% in the sacituzumab govitecan arm and 5% in the chemotherapy arm.
  - Key treatment-related adverse events of grade 3 or higher occurred more often in patients who received sacituzumab govitecan than patients who received chemotherapy: neutropenia (51% vs. 33%), leukopenia (10% vs. 5%), diarrhea (10% vs. <1%), anemia (8% vs. 5%), and febrile neutropenia (6% vs. 2%).

#### PARP inhibitor therapy

Patients with TNBC and a germline BRCA pathogenic variant are eligible for PARP inhibitor therapy. For more information, see the Germline BRCA-Mutated Metastatic Breast Cancer section.

#### Chemotherapy

Chemotherapy may be appropriate for patients with TNBC. For more information, see the Chemotherapy for Metastatic Breast Cancer section.

#### Immunotherapy monotherapy

To date, immunotherapy monotherapy has not demonstrated an OS benefit for patients with metastatic TNBC.

Evidence (pembrolizumab):

1. KEYNOTE-119 (https://www.cancer.gov/clinicaltrials/NCT02555657) (NCT02555657) was a phase III, randomized, open-label, multicenter, international trial that enrolled patients with metastatic TNBC. Patients had received one or two previous systemic treatments for metastatic disease and had previous treatment with an anthracycline or taxane. The trial randomly assigned 622 patients to receive intravenous pembrolizumab 200 mg once every 3 weeks for 35 cycles (pembrolizumab group), or to the investigator's choice of single-drug chemotherapy (capecitabine, eribulin, gemcitabine, or vinorelbine). The primary end point was OS as assessed in each of the following groups: patients with a PD-L1 CPS of 10 or more, patients with a CPS of 1 or more, and all patients.[63]
  - In patients with a PD-L1 CPS of 10 or more, the median OS was 12.7 months (95% CI, 9.9–16.3) in the pembrolizumab group and 11.6 months (95% CI, 8.3–13.7) in the chemotherapy group (HR, 0.78; 95% CI, 0.57–1.06; log-rank P = .057).[63][Level of evidence A1]
  - In patients with a CPS of 1 or more, the median OS was 10.7 months (95% CI, 9.3–12.5) in the pembrolizumab group and 10.2 months (95% CI, 7.9–12.6) in the chemotherapy group (HR, 0.86; 95% CI, 0.69–1.06; log-rank P = .073).
  - Among all patients, the median OS was 9.9 months (95% CI, 8.3–11.4) in the pembrolizumab group and 10.8 months (95% CI, 9.1–12.6) in the chemotherapy group (HR, 0.97; 95% CI, 0.82–1.15).

### Metastatic HER2-Positive Breast Cancer

Antibody therapy targeting the HER2 pathway has been used since the 1990s and has revolutionized the treatment of HER2-positive metastatic breast cancer. Several HER2-targeted agents (e.g., trastuzumab, pertuzumab, trastuzumab emtansine, lapatinib) have been approved for treatment of this disease.

#### Monoclonal antibody therapy

##### Trastuzumab

Approximately 20% to 25% of patients with breast cancer have tumors that overexpress HER2.[64] Trastuzumab is a humanized monoclonal antibody that binds to the HER2 receptor.[64] In patients previously treated with cytotoxic chemotherapy whose tumors overexpress HER2, administration of trastuzumab as a single agent resulted in a response rate of 21%.[65][Level of evidence C3]

Evidence (trastuzumab):

1. In a phase III trial, patients with metastatic disease were randomly assigned to receive either chemotherapy alone (doxorubicin and cyclophosphamide or paclitaxel) or the same chemotherapy plus trastuzumab.[66][Level of evidence A1]
  - Patients treated with chemotherapy plus trastuzumab had an OS advantage over those who received chemotherapy alone (25.1 months vs. 20.3 months, P = .05).[66][Level of evidence A1]

Notably, when combined with doxorubicin, trastuzumab is associated with significant cardiac toxicity.[67]

Clinical trials comparing multiagent chemotherapy plus trastuzumab with single-agent chemotherapy have yielded conflicting results.

- In one randomized study of patients with metastatic breast cancer treated with trastuzumab, paclitaxel, and carboplatin, patients tolerated the combination well and had a longer time to disease progression, compared with those treated with trastuzumab and paclitaxel alone.[68][Level of evidence B1]
- However, no difference in OS, time to disease progression, or response rate was shown in the Breast Cancer International Research Group’s phase III trial (BCIRG-007 (https://www.cancer.gov/clinicaltrials/NCT00047255) [NCT00047255]) that compared carboplatin and docetaxel plus trastuzumab versus docetaxel plus trastuzumab as first-line chemotherapy for metastatic HER2-overexpressing breast cancer.[69][Level of evidence A1]

Outside of a clinical trial, standard first-line treatment for metastatic HER2-overexpressing breast cancer is single-agent chemotherapy plus trastuzumab.

##### Pertuzumab

Pertuzumab is a humanized monoclonal antibody that binds to a different epitope at the HER2 extracellular domain than does trastuzumab. The binding of pertuzumab to HER2 prevents dimerization with other ligand-activated HER receptors, most notably HER3.

Evidence (pertuzumab):

1. The phase III CLEOPATRA (https://www.cancer.gov/clinicaltrials/NCT00567190) trial (NCT00567190) assessed the efficacy and safety of pertuzumab plus trastuzumab plus docetaxel versus placebo plus trastuzumab plus docetaxel, in the first-line HER2-positive metastatic setting.[70,71][Level of evidence A1]
  - With a median follow-up of 50 months, the median OS was 40.8 months in the control group versus 56.5 months in the pertuzumab group (HR favoring pertuzumab group, 0.68; 95% CI, 0.56–0.84; P < .001). Median PFS per investigator assessment was improved by 6.3 months by the addition of pertuzumab (HR, 0.68; 95% CI, 0.58–0.80).
  - Median OS was 56.5 months in the pertuzumab group compared with 40.8 months in the placebo group (HR, 0.68; 95% CI, 0.57–0.84; P < .001).[71] Eight-year landmark OS rates were 37% with the addition of pertuzumab, compared with 23% in the placebo group.[72]
  - The toxicity profile was similar in both treatment groups, with no increase in cardiac toxic effects seen in the pertuzumab combination arm.

##### Trastuzumab emtansine

Trastuzumab emtansine (T-DM1) is an antibody-drug conjugate that incorporates the HER2-targeted antitumor properties of trastuzumab with the cytotoxic activity of the microtubule-inhibitory agent DM1. T-DM1 allows specific intracellular drug delivery to HER2-overexpressing cells, potentially improving the therapeutic index and minimizing exposure of normal tissue.

Evidence (T-DM1):

1. The phase III EMILIA (https://www.cancer.gov/clinicaltrials/NCT00829166) or TDM4370g study (NCT00829166) was a randomized open-label trial that enrolled 991 patients with HER2-overexpressing, unresectable, locally advanced or metastatic breast cancer who were previously treated with trastuzumab and a taxane.[73][Level of evidence A1] Patients were randomly assigned to receive either T-DM1 or lapatinib plus capecitabine.
  - Median PFS was 9.6 months with T-DM1 versus 6.4 months with lapatinib plus capecitabine (HR, 0.65; 95% CI, 0.55–0.77; P < .001).
  - Median OS was longer with T-DM1 versus lapatinib plus capecitabine (29.9 months vs. 25.9 months; HR, 0.75 [95% CI, 0.64–0.88]).[74]
  - The incidences of thrombocytopenia and increased serum aminotransferase levels were higher in patients who received T-DM1, whereas the incidences of diarrhea, nausea, vomiting, and palmar-plantar syndrome were higher in patients who received lapatinib plus capecitabine.
2. Further evidence of T-DM1’s activity in metastatic HER2-overexpressed breast cancer was shown in a randomized phase II study of T-DM1 versus trastuzumab plus docetaxel.[75][Level of evidence B1] This trial randomly assigned 137 women with HER2-overexpressed breast cancer in the first-line metastatic setting.
  - At median follow-up of 14 months, median PFS was 9.2 months with trastuzumab plus docetaxel and 14.2 months with T-DM1 (HR, 0.59; 95% CI, 0.36–0.97).
  - Preliminary OS results were similar between treatment arms.
  - T-DM1 had a favorable safety profile compared with trastuzumab plus docetaxel, with fewer grade 3 adverse events (46.4% vs. 90.9%), adverse events leading to treatment discontinuations (7.2% vs. 40.9%), and serious adverse events (20.3% vs. 25.8%).
3. Evidence of activity of T-DM1 in heavily pretreated patients with metastatic, HER2-overexpressed breast cancer who had received previous trastuzumab and lapatinib was shown in the randomized phase III TH3RESA (https://www.cancer.gov/clinicaltrials/NCT01419197) study (NCT01419197) of T-DM1 versus physician’s choice of treatment.[76][Level of evidence A1] This trial randomly assigned 602 patients in a 2:1 ratio (404 patients assigned to T-DM1 and 198 patients assigned to physician’s choice) and allowed crossover to T-DM1.
  - At a median follow-up of 7.2 months in the T-DM1 group and 6.5 months in the physician’s-choice group, median PFS was 6.2 months in the T-DM1 group and 3.3 months in the physician’s-choice group (HR, 0.528; 95% CI, 0.422–0.661; P < .0001).
  - OS was significantly longer with trastuzumab emtansine versus the treatment of physician’s choice (median OS, 22.7 months vs. 15.8 months; HR, 0.68; 95% CI, 0.54–0.85; P = .0007).[77]
4. The role of T-DM1 as first-line treatment of metastatic HER2-overexpressed breast cancer was evaluated in the phase III MARIANNE (https://www.cancer.gov/clinicaltrials/NCT01120184) trial (NCT01120184).[78][Level of evidence B1] This study randomly assigned 1,095 patients to receive either trastuzumab plus taxane, T-DM1 plus placebo, or T-DM1 plus pertuzumab.
  - The median PFS for these treatment groups was 13.7 months for the trastuzumab-plus-taxane group, 14.1 months for the T-DM1-plus-placebo group, and 15.2 months for the T-DM1-plus-pertuzumab group.
  - There was no significant difference in PFS with T-DM1 plus placebo compared with trastuzumab plus taxane (HR, 0.91; 97.5% CI, 0.73–1.13), or with T-DM1 plus pertuzumab compared with trastuzumab plus taxane (HR, 0.87; 97.5% CI, 0.69–1.08).
  - Therefore, neither T-DM1 plus placebo nor T-DM1 plus pertuzumab showed PFS superiority over trastuzumab plus taxane.

#### Trastuzumab deruxtecan

Trastuzumab deruxtecan is an antibody-drug conjugate that combines trastuzumab with a topoisomerase inhibitor. This drug has demonstrated antitumor activity in patients with advanced HER2-positive breast cancer.

Evidence (trastuzumab deruxtecan):

1. A phase III, multicenter, open-label, randomized trial (DESTINY-Breast03 (https://www.cancer.gov/clinicaltrials/NCT03529110) [NCT03529110]) compared the efficacy and safety of trastuzumab deruxtecan with trastuzumab emtansine. The study included 524 patients with HER2-positive metastatic breast cancer previously treated with a taxane and trastuzumab. PFS was the primary end point.[79]
  - At 12 months, 75.8% of patients who received trastuzumab deruxtecan were alive without disease progression, compared with 34.1% of patients who received trastuzumab emtansine (HR, 0.28; 95% CI, 0.22–0.37; P < .001).
  - Secondary end points were OS, overall response rate, and safety. A total of 94.1% of patients who received trastuzumab deruxtecan were alive at 12 months, compared with 85.9% of patients who received trastuzumab emtansine (HR_death_, 0.55; 95% CI, 0.36–0.86). The overall response rate was 79.7% versus 34.2%, favoring trastuzumab deruxtecan. Grade 3 to 4 drug-related adverse events occurred in 45.1% of patients who received trastuzumab deruxtecan and 38.9% of patients who received trastuzumab emtansine. Interstitial lung disease and pneumonitis occurred in 10.5% of patients who received trastuzumab deruxtecan and 1.9% of patients who received trastuzumab emtansine; none of these events were grade 4 to 5.
  This trial led to a change in the standard of care for patients with HER2-positive metastatic breast cancer, such that patients with prior taxane/trastuzumab therapy proceed to trastuzumab deruxtecan, rather than trastuzumab emtansine, for second-line therapy.

#### Margetuximab

Margetuximab is an Fc-engineered anti-HER2 immunoglobulin G monoclonal antibody that targets the same epitope as trastuzumab, with similar antiproliferative effects. Compared with trastuzumab, margetuximab was designed to increase binding affinity (in vitro) for the activating Fc-gamma receptor and decrease binding affinity for the inhibitory Fc-gamma receptor.

Evidence (margetuximab):

1. The primary PFS analysis from the phase III SOPHIA (https://www.cancer.gov/clinicaltrials/NCT02492711) study (NCT02492711) led to the FDA approval of margetuximab with chemotherapy in patients with HER2-positive metastatic breast cancer who have received as least two previous anti-HER2 regimens, at least one of which was for metastatic disease. The open-label SOPHIA trial randomly assigned 536 patients in the ITT population to receive either margetuximab or trastuzumab. Both groups received investigator's choice of chemotherapy (capecitabine, eribulin, gemcitabine, or vinorelbine). Eligible patients had disease progression after two or more previous anti-HER2 therapies and one to three lines of therapy for metastatic disease. All patients had received previous trastuzumab, all but one had received previous pertuzumab, and 91.2% had received prior ado-trastuzumab emtansine. The sequential primary end points were PFS by central review followed by OS.[80,81][Level of evidence B1]
  - Margetuximab improved primary PFS over trastuzumab with a 24% relative risk reduction (HR, 0.76; 95% CI, 0.59–0.98; P = .03) (median PFS, 5.8 months vs. 4.9 months, favoring margetuximab).
  - The median follow-up was 20.2 months. The median OS in the ITT population was not statistically different between the two treatment groups: 21.6 months in the margetuximab group and 21.9 months in the trastuzumab group (HR, 0.95; 95% CI, 0.77–1.17; P = .620).
  - Grade 3 or higher adverse events that occurred in at least 5% of patients included decreased neutrophil count and anemia in both groups, fatigue in the margetuximab group, and febrile neutropenia in the trastuzumab group.

#### Tyrosine kinase inhibitor (TKI) therapy

The FDA has approved several TKIs for metastatic HER2-positive breast cancer.

##### Tucatinib

Tucatinib is an oral TKI highly selective for the kinase domain of HER2 that minimally inhibits the epidermal growth factor receptor. A phase Ib trial in pretreated patients demonstrated activity when tucatinib was combined with trastuzumab and capecitabine.

Evidence (tucatinib):

1. The HER2CLIMB (https://www.cancer.gov/clinicaltrials/NCT02614794) trial (NCT02614794) compared trastuzumab, capecitabine, and tucatinib with trastuzumab, capecitabine, and placebo in 632 patients who had previously been treated with trastuzumab, pertuzumab, and trastuzumab emtansine. Patients had an Eastern Cooperative Oncology Group (ECOG) performance status of 0 or 1. Patients with and without brain metastases were included. The primary end point was PFS.[82][Level of evidence A1]
  - The median PFS was 7.8 months in the tucatinib combination group and 5.6 months in the placebo combination group (HR, 0.54; 95% CI, 0.42–0.71; P < .001)
  - In an interim analysis conducted at the time of the PFS analysis, median OS was 21.9 months in the tucatinib combination group and 17.4 months in the placebo combination group (HR, 0.66; 95% CI, 0.50–0.88; P = .005)
  - Patients with and without brain metastases benefited from the tucatinib combination.
  - Grade 3 adverse events including diarrhea, palmar-plantar erythrodysesthesia syndrome, and elevated aminotransferase levels were more common in the tucatinib combination group but occurred in fewer than 15% of patients.

##### Neratinib

Neratinib is an irreversible pan-HER TKI (HER1, HER2, and HER4), which is approved in combination with capecitabine for the treatment of patients with advanced or metastatic HER2-positive breast cancer after two or more prior anti–HER2-based regimens in the metastatic setting.

Evidence (neratinib):

1. In the phase III NALA (https://www.cancer.gov/clinicaltrials/NCT01808573) trial (NCT01808573), neratinib and capecitabine were compared with lapatinib and capecitabine in 621 patients with HER2-positive metastatic breast cancer who received two or more HER2-directed regimens in the metastatic setting. PFS and OS were co-primary end points. Secondary end points were time to intervention for metastatic central nervous system (CNS) disease and duration of response. Patients with stable or asymptomatic CNS disease were included.[83][Level of evidence B1]
  - Patients who received neratinib and capecitabine had significantly improved PFS (HR, 0.76; 95% CI, 0.63–0.93). OS between the two arms was not different.
  - The cumulative incidence of intervention for CNS disease was 22.8% (95% CI, 15.5%–30.9%) for patients who received neratinib versus 29.2% (95% CI, 22.5%–36.1%) for patients who received lapatinib.
  - Duration of response was 8.5 months for patients who received neratinib versus 5.6 months for patients who received lapatinib.
  - Diarrhea, nausea, palmar-plantar erythrodysesthesia, and vomiting were the most common adverse events, with grade 3 diarrhea occurring in 24.4% of patients who received neratinib. Antidiarrheal medications were required in the neratinib arm and used by 98.3% of those patients.
  - Quality-of-life scores were similar between the two groups.

##### Lapatinib

Lapatinib is an orally administered TKI of both HER2 and the epidermal growth factor receptor. Lapatinib plus capecitabine has shown activity in patients who have HER2-positive metastatic breast cancer that progressed after treatment with trastuzumab.

Evidence (lapatinib):

1. A nonblinded randomized trial (GSK-EGF100151 (https://www.cancer.gov/clinicaltrials/NCT00078572) [NCT00078572]) compared the combination of capecitabine and lapatinib with capecitabine alone in 324 patients with locally advanced or metastatic disease that progressed after therapies that included anthracyclines, taxanes, and trastuzumab.[84][Level of evidence A1]
  - Median time-to-disease progression in the lapatinib-plus-capecitabine arm was 8.4 months compared with 4.4 months in the capecitabine-alone arm (HR, 0.49; 95% CI, 0.34–0.71; P < .001).
  - There was no difference in OS (HR, 0.92; 95% CI, 0.58–1.46; P = .72).[84][Level of evidence A1]
  - Patients on combination therapy were more likely to develop diarrhea, rash, and dyspepsia. For more information, see the Diarrhea section in Gastrointestinal Complications.
  - No data are available on quality of life or treatment after disease progression.

#### mTOR inhibition

Evidence of mTOR inhibitor activity in HER2-positive breast cancer was shown in the double-blind, placebo-controlled, phase III BOLERO-3 (https://www.cancer.gov/clinicaltrials/NCT01007942) trial (NCT01007942).[85]

1. In the BOLERO-3 trial, 569 patients with HER2-positive, trastuzumab-resistant, breast cancer, who had received previous taxane therapy, were randomly assigned to receive either everolimus plus trastuzumab plus vinorelbine, or placebo plus trastuzumab plus vinorelbine.[85][Level of evidence B1]
  - At median follow-up of 20.2 months, median PFS was 7.0 months in the everolimus group versus 5.78 months in the placebo group (HR, 0.78; 95% CI, 0.65–0.95; P = .0067).
  - Serious adverse events were reported in 117 patients (42%) in the everolimus group and 55 patients (20%) in the placebo group.
  - Final OS outcomes for this trial have not yet been reported.

### Germline BRCA-Mutated Metastatic Breast Cancer

For patients with metastatic breast cancer who carry germline BRCA1 or BRCA2 pathogenic variants, oral PARP inhibitors have shown activity. BRCA1 and BRCA2 are tumor suppressor genes that encode proteins involved in DNA repair (via the homologous recombination repair pathway). PARP plays a critical role in DNA repair and has been studied as therapy for patients with breast cancer who harbor germline BRCA1 or BRCA2 variants.

#### Olaparib

Evidence (olaparib):

1. The OlympiAD (https://www.cancer.gov/clinicaltrials/NCT02000622) trial (NCT02000622) was a randomized, open-label, phase III trial that randomly assigned 302 patients, in a 2:1 ratio, to receive olaparib (300 mg bid) or standard therapy (either single-agent capecitabine, eribulin, or vinorelbine).[86] All patients had received anthracycline and taxane previously in either the adjuvant or metastatic setting, and those with hormone receptor–positive disease had also received endocrine therapy previously.
  - Median PFS was significantly longer in the olaparib group than in the standard therapy group (7.0 months vs. 4.2. months; HR_disease progression or death_, 0.58; 95% CI, 0.43–0.80; P < .001).[86][Level of evidence A1]
  - OS did not differ between the two treatment groups with median time to death (HR_death_, 0.90; 95% CI, 0.63–1.29; P = .57).
  - Olaparib was less toxic than standard therapy, with a rate of grade 3 or higher adverse events of 36.6% in the olaparib group and 50.5% in the standard therapy group, with anemia, nausea, vomiting, fatigue, headache, and cough occurring more frequently with olaparib; neutropenia, palmar-plantar erythrodysesthesia, and liver-function test abnormalities occurred more commonly with chemotherapy.
  - Of note, subset analysis suggested that PFS improvement with olaparib appeared greater in the TNBC subgroup (HR, 0.43; 95% CI, 0.29–0.63) than in the hormone receptor–positive subgroup (HR, 0.82; 95% CI, 0.55–1.26).

#### Talazoparib

Evidence (talazoparib):

1. The EMBRACA (https://www.cancer.gov/clinicaltrials/NCT01945775) trial (NCT01945775) was a randomized, open label, phase III trial that assigned 431 patients with germline BRCA1 or BRCA2 pathogenic variants and locally advanced or metastatic breast cancer in a 2:1 ratio to talazoparib (1 mg PO qd) or standard single-agent chemotherapy of the physician’s choice (eribulin, capecitabine, gemcitabine, or vinorelbine).[87] All patients had received previous treatment with an anthracycline, taxane, or both. Patients had received three or fewer lines of cytotoxic chemotherapy for advanced breast cancer. Previous platinum therapy in the setting of early breast cancer was permitted if it was completed at least 6 months before progressive disease or if there was no objective progression while on platinum therapy in the advanced-disease setting. Hormone receptor–positive and hormone receptor–negative patients were enrolled.
  - Median PFS was significantly longer in the talazoparib group than in the standard therapy group (8.6 months vs. 5.6 months; HR_disease progression or death_, 0.54; 95% CI, 0.41–0.71; P < .001).
  - Benefits were observed in all subgroups, although CIs were wide in the subgroup of patients who had received previous platinum therapy.
  - Median OS did not differ between the two groups (22.3 months vs. 19.5 months; HR_death_, 0.76; 95% CI, 0.55–1.06; P = .11), although survival data are not yet mature.
  - The primary toxicity observed with talazoparib was myelosuppression, especially anemia.
  - Patient-reported outcome data demonstrated more favorable effects of talazoparib than standard chemotherapy on quality-of-life measures.[88]

For more information, see Genetics of Breast and Gynecologic Cancers.

### High Tumor Mutational Burden Breast Cancer

An established biomarker for checkpoint inhibitor immunotherapy is high somatic tumor mutational burden (TMB). TMB is the number of mutations within the coding region of a tumor genome and is reported as mutations per megabase (Mut/Mb). TMB is high (≥10) in approximately 5% of breast cancers.[89] Highest median TMB is noted in triple-negative tumors and lowest median TMB is noted in ER-positive/HER2-negative patients.

#### Pembrolizumab

Evidence (pembrolizumab):

1. The FDA approved pembrolizumab for the treatment of metastatic solid tumors with a TMB of at least 10 Mut/Mb, based on the KEYNOTE-158 trial.[90]
  - KEYNOTE-158 (https://www.cancer.gov/clinicaltrials/NCT02628067) (NCT02628067) was a multicohort, open-label, nonrandomized, phase II multinational study. Patients had metastatic solid malignancies, treated with at least one previous line of therapy. Participants received pembrolizumab 200 mg intravenously every 3 weeks for up to 35 cycles. TMB was assessed in formalin-fixed paraffin-embedded tumor samples using the FoundationOne CDx assay. A total of 105 of 805 evaluable patients had high TMB (≥10 Mut/Mb).
  - The primary outcome was objective response rate. Objective responses were observed in 30 of 102 patients (29%) in the TMB-high group and 43 of 688 patients (6%) in the non-TMB-high group. Grade 3 to 5 treatment-related adverse events occurred in 16 patients. One patient died of pneumonia that was assessed by the investigator to be treatment related.
2. The TAPUR (https://www.cancer.gov/clinicaltrials/NCT02693535) study (NCT02693535) was a phase II basket trial done to identify the efficacy of commercially available targeted agents in patients with advanced cancers and genomic alterations known to be drug targets. TAPUR results from patients with metastatic breast cancer and high TMB have been reported. The primary end point was disease control (objective response or stable disease for ≥16 weeks).[91][Level of evidence C3]
  - The study enrolled 28 patients with metastatic breast cancer and high TMB. TMB ranged from 9 to 37 Mut/Mb.
  - Disease control was noted in 37% of patients, with objective response noted in 21% of patients.
  - The median PFS was 10.6 weeks and the median OS was 30.6 weeks.

### Chemotherapy for Metastatic Breast Cancer

Patients receiving hormone therapy whose tumors have progressed are candidates for cytotoxic chemotherapy. There are no data suggesting that combination therapy results in an OS benefit over single-agent therapy. Patients with hormone receptor–negative tumors and those with visceral metastases or symptomatic disease are also candidates for cytotoxic agents.[92]

Single agents that have shown activity in metastatic breast cancer include:

- Anthracyclines.
  - Doxorubicin.
  - Epirubicin.
  - Liposomal doxorubicin.[93-96]
  - Mitoxantrone.
- Taxanes.
  - Paclitaxel.[97,98]
  - Docetaxel.
  - Albumin-bound nanoparticle paclitaxel (ABI-007 or Abraxane).[99,100]
- Alkylating agents.
  - Cyclophosphamide.
- Fluoropyrimidines.
  - Capecitabine.[101-103]
  - Fluorouracil (5-FU).
- Antimetabolites.
  - Methotrexate.
- Vinca alkaloids.
  - Vinorelbine.[104]
  - Vinblastine.
  - Vincristine.
- Platinum.
  - Carboplatin.
  - Cisplatin.
- Other.
  - Gemcitabine.[105]
  - Mitomycin.
  - Eribulin mesylate.[106,107]
  - Ixabepilone.[108]

Combination regimens that have shown activity in metastatic breast cancer include:

- AC: Doxorubicin and cyclophosphamide.[109]
- EC: Epirubicin and cyclophosphamide.[110]
- Docetaxel and doxorubicin.[111]
- CAF: Cyclophosphamide, doxorubicin, and 5-FU.[112]
- CMF: Cyclophosphamide, methotrexate, and 5-FU.[113]
- Doxorubicin and paclitaxel.[114,115]
- Docetaxel and capecitabine.[116]
- Vinorelbine and epirubicin.[117]
- Capecitabine and ixabepilone.[118]
- Carboplatin and gemcitabine.[119]
- Gemcitabine and paclitaxel.[120]

There are no data suggesting that combination therapy results in an OS benefit over single-agent therapy. An ECOG intergroup study (E-1193) randomly assigned patients to receive paclitaxel and doxorubicin, given both as a combination and sequentially.[121] Although response rate and time to disease progression were both better for the combination, survival was the same in both groups.[121][Level of evidence A1]; [122,123]

The selection of therapy in individual patients is influenced by the following factors:

- Rate of disease progression.
- Presence or absence of comorbid medical conditions.
- Physician/patient preference.

Sequential use of single agents or combinations can be used for patients who relapse with metastatic disease. Combination chemotherapy is often given if there is evidence of rapidly progressive disease or visceral crisis. Combinations of chemotherapy and hormone therapy have not shown an OS advantage over the sequential use of these agents.[124,125] A systematic review of 17 randomized trials found that the addition of one or more chemotherapy drugs to a chemotherapy regimen in the attempt to intensify the treatment improved tumor response but had no effect on OS.[126][Level of evidence A1]

The following factors may be considered for decisions regarding the duration of chemotherapy:

- Patient preference and goals of treatment.
- Presence of toxicities from previous therapies.
- Availability of alternative treatment options.

The optimal time for patients with responsive or stable disease has been studied by several groups. For patients who attain a complete response to initial therapy, two randomized trials have shown a prolonged DFS after immediate treatment with a different chemotherapy regimen compared with observation and treatment upon relapse.[127,128][Level of evidence A1] Neither of these studies, however, showed an improvement in OS for patients who received immediate treatment; in one of these studies,[128] survival was actually worse in the group that was treated immediately. Similarly, no difference in survival was noted when patients with partial response or stable disease after initial therapy were randomly assigned to receive either a different chemotherapy versus observation [129] or a different chemotherapy regimen given at higher versus lower doses.[130][Level of evidence A1] However, 324 patients who achieved disease control were randomly assigned to maintenance chemotherapy or observation. Patients who received maintenance chemotherapy (paclitaxel and gemcitabine) had improved PFS at 6 months and improved OS. This was associated with an increased rate of adverse events.[131][Level of evidence A1] Because there is no standard approach for treating metastatic disease, patients requiring second-line regimens are good candidates for clinical trials.

#### Capecitabine and fluorouracil dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[132,133] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[132-134] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[135-137] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[138] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[139]

#### Cardiac toxic effects with anthracyclines

The potential for anthracycline-induced cardiac toxic effects should be considered in the selection of chemotherapeutic regimens for selected patients. Recognized risk factors for cardiac toxicity include:

- Advanced age.
- Previous chest-wall radiation therapy.
- Previous anthracycline exposure.
- Hypertension and known underlying heart disease.
- Diabetes.

The cardioprotective drug dexrazoxane decreased the risk of doxorubicin-induced cardiac toxicity in patients in controlled studies. The use of this agent has permitted patients to receive higher cumulative doses of doxorubicin and has allowed patients with cardiac risk factors to receive doxorubicin.[140-143] The risk of cardiac toxicity may also be reduced by giving doxorubicin as a continuous intravenous infusion.[144] The American Society of Clinical Oncology guidelines suggest the use of dexrazoxane in patients with metastatic cancer who have received a cumulative dose of doxorubicin of 300 mg/m^2^ or more when further treatment with an anthracycline is likely to be of benefit.[145] Dexrazoxane has a similar protective effect in patients receiving epirubicin.[146]

### Surgical Treatment for Metastatic Breast Cancer

The ECOG 2108 (https://www.cancer.gov/clinicaltrials/NCT01242800) trial (NCT01242800) evaluated the potential benefit of breast locoregional interventions in patients with metastatic breast cancer. Women presenting with metastatic breast cancer and an intact primary tumor received systemic therapy for 4 to 8 months. If disease progression did not occur, patients were randomly assigned to receive locoregional therapy for the primary site (surgery and radiation therapy, per standards for nonmetastatic disease) or to continue systemic therapy. Of the 256 randomly assigned patients, 125 received early locoregional therapy. The primary end point was OS.[147]

- The 3-year OS was 67.9% in the systemic therapy group and 68.4% in the locoregional therapy group (HR, 1.11; 90% CI, 0.82–1.52; P = .57). The median OS was 53.1 months (95% CI, 47.9–not estimable) in the systemic therapy group and 54.9 months (95% CI, 46.7–not estimable) in the locoregional therapy group.
- Locoregional disease progression was less frequent in patients who received locoregional therapy (3-year locoregional progression rate, 16.3% vs. 39.8%; P < .001).

Surgery may be indicated for select patients. For example, patients may need surgery if the following issues occur:

- Fungating/painful breast lesions (mastectomy).
- Parenchymal brain or vertebral metastases with spinal cord compression.
- Pathological (or impending) fractures.
- Pleural or pericardial effusions.

For more information about pleural and pericardial effusions, see Cardiopulmonary Syndromes.

### Radiation Therapy for Metastatic Breast Cancer

Radiation therapy has a major role in the palliation of localized symptomatic metastases.[148] Indications for external-beam radiation therapy include:

- Painful bony metastases.
- Unresectable central nervous system metastases (i.e., brain, meninges, and spinal cord).
- Bronchial obstruction.
- Fungating/painful breast or chest wall lesions.
- After surgery for decompression of intracranial or spinal cord metastases.
- After fixation of pathological fractures.

Strontium chloride Sr 89, a systemically administered radionuclide, can be given for palliation of diffuse bony metastases.[149,150]

### Bone-Modifying Therapy for Metastatic Breast Cancer

The use of bone-modifying therapy to reduce skeletal morbidity in patients with bone metastases should be considered.[151] Results of randomized trials of pamidronate and clodronate in patients with bony metastatic disease show decreased skeletal morbidity.[152-154][Level of evidence A3] Zoledronate has been at least as effective as pamidronate.[155]

The optimal dosing schedule for zoledronate was studied in CALGB-70604 (https://www.cancer.gov/clinicaltrials/NCT00869206) (Alliance; NCT00869206), which randomly assigned 1,822 patients, 855 of whom had metastatic breast cancer, to receive zoledronic acid every 4 weeks or every 12 weeks.[156] Skeletal-related events were similar in both groups, with 260 patients (29.5%) in the zoledronate every-4-week dosing group and 253 patients (28.6%) in the zoledronate every-12-week dosing group experiencing at least one skeletal-related event (risk difference of -0.3% [1-sided 95% CI, -4% to infinity]; P < .001 for noninferiority).[156][Level of evidence B1] This study suggests that the longer dosing interval of zoledronate every 12 weeks is a reasonable treatment option.

The monoclonal antibody denosumab inhibits the receptor activator of nuclear factor kappa beta ligand (RANKL). A meta-analysis of three phase III trials (NCT00321464 (https://www.cancer.gov/clinicaltrials/NCT00321464), NCT00321620 (https://www.cancer.gov/clinicaltrials/NCT00321620), and NCT00330759 (https://www.cancer.gov/clinicaltrials/NCT00330759)) comparing zoledronate versus denosumab for management of bone metastases suggests that denosumab is similar to zoledronate in reducing the risk of a first skeletal-related event.[157]

For more information about bisphosphonates, see Cancer Pain.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

National Cancer Institute: SEER Cancer Stat Facts: Female Breast Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/breast.html). Last accessed April 9, 2025.
Seidman AD, Bordeleau L, Fehrenbacher L, et al.: National Cancer Institute Breast Cancer Steering Committee Working Group Report on Meaningful and Appropriate End Points for Clinical Trials in Metastatic Breast Cancer. J Clin Oncol 36 (32): 3259-3268, 2018.30212295
Rugo HS, Diéras V, Gelmon KA, et al.: Impact of palbociclib plus letrozole on patient-reported health-related quality of life: results from the PALOMA-2 trial. Ann Oncol 29 (4): 888-894, 2018.29360932
Rugo HS, Finn RS, Diéras V, et al.: Palbociclib plus letrozole as first-line therapy in estrogen receptor-positive/human epidermal growth factor receptor 2-negative advanced breast cancer with extended follow-up. Breast Cancer Res Treat 174 (3): 719-729, 2019.30632023
Turner NC, Ro J, André F, et al.: Palbociclib in Hormone-Receptor-Positive Advanced Breast Cancer. N Engl J Med 373 (3): 209-19, 2015.26030518
Verma S, O'Shaughnessy J, Burris HA, et al.: Health-related quality of life of postmenopausal women with hormone receptor-positive, human epidermal growth factor receptor 2-negative advanced breast cancer treated with ribociclib + letrozole: results from MONALEESA-2. Breast Cancer Res Treat 170 (3): 535-545, 2018.29654415
Janni W, Alba E, Bachelot T, et al.: First-line ribociclib plus letrozole in postmenopausal women with HR+ , HER2- advanced breast cancer: Tumor response and pain reduction in the phase 3 MONALEESA-2 trial. Breast Cancer Res Treat 169 (3): 469-479, 2018.29404806
Kaufman PA, Toi M, Neven P, et al.: Health-Related Quality of Life in MONARCH 2: Abemaciclib plus Fulvestrant in Hormone Receptor-Positive, HER2-Negative Advanced Breast Cancer After Endocrine Therapy. Oncologist 25 (2): e243-e251, 2020.32043763
Gao JJ, Cheng J, Bloomquist E, et al.: CDK4/6 inhibitor treatment for patients with hormone receptor-positive, HER2-negative, advanced or metastatic breast cancer: a US Food and Drug Administration pooled analysis. Lancet Oncol 21 (2): 250-260, 2020.31859246
Finn RS, Crown JP, Lang I, et al.: The cyclin-dependent kinase 4/6 inhibitor palbociclib in combination with letrozole versus letrozole alone as first-line treatment of oestrogen receptor-positive, HER2-negative, advanced breast cancer (PALOMA-1/TRIO-18): a randomised phase 2 study. Lancet Oncol 16 (1): 25-35, 2015.25524798
Finn RS, Martin M, Rugo HS, et al.: Palbociclib and Letrozole in Advanced Breast Cancer. N Engl J Med 375 (20): 1925-1936, 2016.27959613
Hortobagyi GN, Stemmer SM, Burris HA, et al.: Ribociclib as First-Line Therapy for HR-Positive, Advanced Breast Cancer. N Engl J Med 375 (18): 1738-1748, 2016.27717303
Huober J, Barrios CH, Niikura N, et al.: Atezolizumab With Neoadjuvant Anti-Human Epidermal Growth Factor Receptor 2 Therapy and Chemotherapy in Human Epidermal Growth Factor Receptor 2-Positive Early Breast Cancer: Primary Results of the Randomized Phase III IMpassion050 Trial. J Clin Oncol 40 (25): 2946-2956, 2022.35763704
Hortobagyi GN, Stemmer SM, Burris HA, et al.: Overall Survival with Ribociclib plus Letrozole in Advanced Breast Cancer. N Engl J Med 386 (10): 942-950, 2022.35263519
Slamon DJ, Neven P, Chia S, et al.: Phase III Randomized Study of Ribociclib and Fulvestrant in Hormone Receptor-Positive, Human Epidermal Growth Factor Receptor 2-Negative Advanced Breast Cancer: MONALEESA-3. J Clin Oncol 36 (24): 2465-2472, 2018.29860922
Slamon DJ, Neven P, Chia S, et al.: Overall Survival with Ribociclib plus Fulvestrant in Advanced Breast Cancer. N Engl J Med 382 (6): 514-524, 2020.31826360
Tripathy D, Im SA, Colleoni M, et al.: Ribociclib plus endocrine therapy for premenopausal women with hormone-receptor-positive, advanced breast cancer (MONALEESA-7): a randomised phase 3 trial. Lancet Oncol 19 (7): 904-915, 2018.29804902
Im SA, Lu YS, Bardia A, et al.: Overall Survival with Ribociclib plus Endocrine Therapy in Breast Cancer. N Engl J Med 381 (4): 307-316, 2019.31166679
Goetz MP, Toi M, Campone M, et al.: MONARCH 3: Abemaciclib As Initial Therapy for Advanced Breast Cancer. J Clin Oncol 35 (32): 3638-3646, 2017.28968163
Goetz MP, Toi M, Huober J, et al.: Abemaciclib plus a nonsteroidal aromatase inhibitor as initial therapy for HR+, HER2- advanced breast cancer: final overall survival results of MONARCH 3. Ann Oncol 35 (8): 718-727, 2024.38729566
Cristofanilli M, Turner NC, Bondarenko I, et al.: Fulvestrant plus palbociclib versus fulvestrant plus placebo for treatment of hormone-receptor-positive, HER2-negative metastatic breast cancer that progressed on previous endocrine therapy (PALOMA-3): final analysis of the multicentre, double-blind, phase 3 randomised controlled trial. Lancet Oncol 17 (4): 425-39, 2016.26947331
Turner NC, Slamon DJ, Ro J, et al.: Overall Survival with Palbociclib and Fulvestrant in Advanced Breast Cancer. N Engl J Med 379 (20): 1926-1936, 2018.30345905
Sledge GW, Toi M, Neven P, et al.: MONARCH 2: Abemaciclib in Combination With Fulvestrant in Women With HR+/HER2- Advanced Breast Cancer Who Had Progressed While Receiving Endocrine Therapy. J Clin Oncol 35 (25): 2875-2884, 2017.28580882
Sledge GW, Toi M, Neven P, et al.: The Effect of Abemaciclib Plus Fulvestrant on Overall Survival in Hormone Receptor-Positive, ERBB2-Negative Breast Cancer That Progressed on Endocrine Therapy-MONARCH 2: A Randomized Clinical Trial. JAMA Oncol 6 (1): 116-124, 2020.31563959
Kalinsky K, Bianchini G, Hamilton E, et al.: Abemaciclib plus fulvestrant vs fulvestrant alone for HR+, HER2- advanced breast cancer following progression on a prior CDK4/6 inhibitor plus endocrine therapy: primary outcome of the phase 3 postMONARCH trial. [Abstract] J Clin Oncol 42 (Suppl 17): A-LBA1001, 2024.
Dickler MN, Tolaney SM, Rugo HS, et al.: MONARCH 1, A Phase II Study of Abemaciclib, a CDK4 and CDK6 Inhibitor, as a Single Agent, in Patients with Refractory HR+/HER2- Metastatic Breast Cancer. Clin Cancer Res 23 (17): 5218-5224, 2017.28533223
Baselga J, Campone M, Piccart M, et al.: Everolimus in postmenopausal hormone-receptor-positive advanced breast cancer. N Engl J Med 366 (6): 520-9, 2012.22149876
Piccart M, Hortobagyi GN, Campone M, et al.: Everolimus plus exemestane for hormone-receptor-positive, human epidermal growth factor receptor-2-negative advanced breast cancer: overall survival results from BOLERO-2†. Ann Oncol 25 (12): 2357-62, 2014.25231953
Bachelot T, Bourgier C, Cropet C, et al.: Randomized phase II trial of everolimus in combination with tamoxifen in patients with hormone receptor-positive, human epidermal growth factor receptor 2-negative metastatic breast cancer with prior exposure to aromatase inhibitors: a GINECO study. J Clin Oncol 30 (22): 2718-24, 2012.22565002
Kornblum N, Zhao F, Manola J, et al.: Randomized Phase II Trial of Fulvestrant Plus Everolimus or Placebo in Postmenopausal Women With Hormone Receptor-Positive, Human Epidermal Growth Factor Receptor 2-Negative Metastatic Breast Cancer Resistant to Aromatase Inhibitor Therapy: Results of PrE0102. J Clin Oncol 36 (16): 1556-1563, 2018.29664714
Rugo HS, Seneviratne L, Beck JT, et al.: Prevention of everolimus-related stomatitis in women with hormone receptor-positive, HER2-negative metastatic breast cancer using dexamethasone mouthwash (SWISH): a single-arm, phase 2 trial. Lancet Oncol 18 (5): 654-662, 2017.28314691
Turner NC, Oliveira M, Howell SJ, et al.: Capivasertib in Hormone Receptor-Positive Advanced Breast Cancer. N Engl J Med 388 (22): 2058-2070, 2023.37256976
André F, Ciruelos E, Rubovszky G, et al.: Alpelisib for PIK3CA-Mutated, Hormone Receptor-Positive Advanced Breast Cancer. N Engl J Med 380 (20): 1929-1940, 2019.31091374
Bidard FC, Kaklamani VG, Neven P, et al.: Elacestrant (oral selective estrogen receptor degrader) Versus Standard Endocrine Therapy for Estrogen Receptor-Positive, Human Epidermal Growth Factor Receptor 2-Negative Advanced Breast Cancer: Results From the Randomized Phase III EMERALD Trial. J Clin Oncol 40 (28): 3246-3256, 2022.35584336
Yardley DA, Ismail-Khan RR, Melichar B, et al.: Randomized phase II, double-blind, placebo-controlled study of exemestane with or without entinostat in postmenopausal women with locally recurrent or metastatic estrogen receptor-positive breast cancer progressing on treatment with a nonsteroidal aromatase inhibitor. J Clin Oncol 31 (17): 2128-35, 2013.23650416
Connolly RM, Zhao F, Miller KD, et al.: E2112: Randomized Phase III Trial of Endocrine Therapy Plus Entinostat or Placebo in Hormone Receptor-Positive Advanced Breast Cancer. A Trial of the ECOG-ACRIN Cancer Research Group. J Clin Oncol 39 (28): 3171-3181, 2021.34357781
Bonneterre J, Thürlimann B, Robertson JF, et al.: Anastrozole versus tamoxifen as first-line therapy for advanced breast cancer in 668 postmenopausal women: results of the Tamoxifen or Arimidex Randomized Group Efficacy and Tolerability study. J Clin Oncol 18 (22): 3748-57, 2000.11078487 20530729
Nabholtz JM, Buzdar A, Pollak M, et al.: Anastrozole is superior to tamoxifen as first-line therapy for advanced breast cancer in postmenopausal women: results of a North American multicenter randomized trial. Arimidex Study Group. J Clin Oncol 18 (22): 3758-67, 2000.11078488 20530730
Mouridsen H, Gershanovich M, Sun Y, et al.: Phase III study of letrozole versus tamoxifen as first-line therapy of advanced breast cancer in postmenopausal women: analysis of survival and update of efficacy from the International Letrozole Breast Cancer Group. J Clin Oncol 21 (11): 2101-9, 2003.12775735 22660330
Mauri D, Pavlidis N, Polyzos NP, et al.: Survival with aromatase inhibitors and inactivators versus standard hormonal therapy in advanced breast cancer: meta-analysis. J Natl Cancer Inst 98 (18): 1285-91, 2006.16985247
Robertson JFR, Bondarenko IM, Trishkina E, et al.: Fulvestrant 500 mg versus anastrozole 1 mg for hormone receptor-positive advanced breast cancer (FALCON): an international, randomised, double-blind, phase 3 trial. Lancet 388 (10063): 2997-3005, 2016.27908454
Osborne CK, Pippen J, Jones SE, et al.: Double-blind, randomized trial comparing the efficacy and tolerability of fulvestrant versus anastrozole in postmenopausal women with advanced breast cancer progressing on prior endocrine therapy: results of a North American trial. J Clin Oncol 20 (16): 3386-95, 2002.12177098 22166563
Howell A, Robertson JF, Quaresma Albano J, et al.: Fulvestrant, formerly ICI 182,780, is as effective as anastrozole in postmenopausal women with advanced breast cancer progressing after prior endocrine treatment. J Clin Oncol 20 (16): 3396-403, 2002.12177099 22166564
Henderson IC: A rose is no longer a rose. J Clin Oncol 20 (16): 3365-8, 2002.12177095 22166560
Flemming J, Madarnas Y, Franek JA: Fulvestrant for systemic therapy of locally advanced or metastatic breast cancer in postmenopausal women: a systematic review. Breast Cancer Res Treat 115 (2): 255-68, 2009.18683044
Chia S, Gradishar W, Mauriac L, et al.: Double-blind, randomized placebo controlled trial of fulvestrant compared with exemestane after prior nonsteroidal aromatase inhibitor therapy in postmenopausal women with hormone receptor-positive, advanced breast cancer: results from EFECT. J Clin Oncol 26 (10): 1664-70, 2008.18316794
Di Leo A, Jerusalem G, Petruzelka L, et al.: Results of the CONFIRM phase III trial comparing fulvestrant 250 mg with fulvestrant 500 mg in postmenopausal women with estrogen receptor-positive advanced breast cancer. J Clin Oncol 28 (30): 4594-600, 2010.20855825
Mehta RS, Barlow WE, Albain KS, et al.: Combination anastrozole and fulvestrant in metastatic breast cancer. N Engl J Med 367 (5): 435-44, 2012.22853014
Bergh J, Jönsson PE, Lidbrink EK, et al.: FACT: an open-label randomized phase III study of fulvestrant and anastrozole in combination compared with anastrozole alone as first-line therapy for patients with receptor-positive postmenopausal breast cancer. J Clin Oncol 30 (16): 1919-25, 2012.22370325
Mehta RS, Barlow WE, Albain KS, et al.: Overall Survival with Fulvestrant plus Anastrozole in Metastatic Breast Cancer. N Engl J Med 380 (13): 1226-1234, 2019.30917258
Vidula N, Yau C, Rugo HS: Trop2 gene expression (Trop2e) in primary breast cancer (BC): Correlations with clinical and tumor characteristics. [Abstract] J Clin Oncol 35 (15 Suppl): A-1075, 2017.
Rugo HS, Bardia A, Marmé F, et al.: Sacituzumab Govitecan in Hormone Receptor-Positive/Human Epidermal Growth Factor Receptor 2-Negative Metastatic Breast Cancer. J Clin Oncol 40 (29): 3365-3376, 2022.36027558
Modi S, Park H, Murthy RK, et al.: Antitumor Activity and Safety of Trastuzumab Deruxtecan in Patients With HER2-Low-Expressing Advanced Breast Cancer: Results From a Phase Ib Study. J Clin Oncol 38 (17): 1887-1896, 2020.32058843
Modi S, Jacot W, Yamashita T, et al.: Trastuzumab Deruxtecan in Previously Treated HER2-Low Advanced Breast Cancer. N Engl J Med 387 (1): 9-20, 2022.35665782
Bardia A, Hu X, Dent R, et al.: Trastuzumab Deruxtecan after Endocrine Therapy in Metastatic Breast Cancer. N Engl J Med 391 (22): 2110-2122, 2024.39282896
Cortes J, Cescon DW, Rugo HS, et al.: Pembrolizumab plus chemotherapy versus placebo plus chemotherapy for previously untreated locally recurrent inoperable or metastatic triple-negative breast cancer (KEYNOTE-355): a randomised, placebo-controlled, double-blind, phase 3 clinical trial. Lancet 396 (10265): 1817-1828, 2020.33278935
Cortes J, Rugo HS, Cescon DW, et al.: Pembrolizumab plus Chemotherapy in Advanced Triple-Negative Breast Cancer. N Engl J Med 387 (3): 217-226, 2022.35857659
Schmid P, Adams S, Rugo HS, et al.: Atezolizumab and Nab-Paclitaxel in Advanced Triple-Negative Breast Cancer. N Engl J Med 379 (22): 2108-2121, 2018.30345906
Emens LA, Adams S, Barrios CH, et al.: First-line atezolizumab plus nab-paclitaxel for unresectable, locally advanced, or metastatic triple-negative breast cancer: IMpassion130 final overall survival analysis. Ann Oncol 32 (8): 983-993, 2021.34272041
Miles D, Gligorov J, André F, et al.: Primary results from IMpassion131, a double-blind, placebo-controlled, randomised phase III trial of first-line paclitaxel with or without atezolizumab for unresectable locally advanced/metastatic triple-negative breast cancer. Ann Oncol 32 (8): 994-1004, 2021.34219000
Bardia A, Mayer IA, Vahdat LT, et al.: Sacituzumab Govitecan-hziy in Refractory Metastatic Triple-Negative Breast Cancer. N Engl J Med 380 (8): 741-751, 2019.30786188
Bardia A, Hurvitz SA, Tolaney SM, et al.: Sacituzumab Govitecan in Metastatic Triple-Negative Breast Cancer. N Engl J Med 384 (16): 1529-1541, 2021.33882206
Winer EP, Lipatov O, Im SA, et al.: Pembrolizumab versus investigator-choice chemotherapy for metastatic triple-negative breast cancer (KEYNOTE-119): a randomised, open-label, phase 3 trial. Lancet Oncol 22 (4): 499-511, 2021.33676601
Pegram MD, Pauletti G, Slamon DJ: HER-2/neu as a predictive marker of response to breast cancer therapy. Breast Cancer Res Treat 52 (1-3): 65-77, 1998.10066073 99163956
Cobleigh MA, Vogel CL, Tripathy D, et al.: Multinational study of the efficacy and safety of humanized anti-HER2 monoclonal antibody in women who have HER2-overexpressing metastatic breast cancer that has progressed after chemotherapy for metastatic disease. J Clin Oncol 17 (9): 2639-48, 1999.10561337 20030066
Slamon DJ, Leyland-Jones B, Shak S, et al.: Use of chemotherapy plus a monoclonal antibody against HER2 for metastatic breast cancer that overexpresses HER2. N Engl J Med 344 (11): 783-92, 2001.11248153 21128533
Seidman A, Hudis C, Pierri MK, et al.: Cardiac dysfunction in the trastuzumab clinical trials experience. J Clin Oncol 20 (5): 1215-21, 2002.11870163 21859403
Robert N, Leyland-Jones B, Asmar L, et al.: Randomized phase III study of trastuzumab, paclitaxel, and carboplatin compared with trastuzumab and paclitaxel in women with HER-2-overexpressing metastatic breast cancer. J Clin Oncol 24 (18): 2786-92, 2006.16782917
Valero V, Forbes J, Pegram MD, et al.: Multicenter phase III randomized trial comparing docetaxel and trastuzumab with docetaxel, carboplatin, and trastuzumab as first-line chemotherapy for patients with HER2-gene-amplified metastatic breast cancer (BCIRG 007 study): two highly active therapeutic regimens. J Clin Oncol 29 (2): 149-56, 2011.21115860
Baselga J, Cortés J, Kim SB, et al.: Pertuzumab plus trastuzumab plus docetaxel for metastatic breast cancer. N Engl J Med 366 (2): 109-19, 2012.22149875
Swain SM, Baselga J, Kim SB, et al.: Pertuzumab, trastuzumab, and docetaxel in HER2-positive metastatic breast cancer. N Engl J Med 372 (8): 724-34, 2015.25693012
Swain SM, Miles D, Kim SB, et al.: Pertuzumab, trastuzumab, and docetaxel for HER2-positive metastatic breast cancer (CLEOPATRA): end-of-study results from a double-blind, randomised, placebo-controlled, phase 3 study. Lancet Oncol 21 (4): 519-530, 2020.32171426
Verma S, Miles D, Gianni L, et al.: Trastuzumab emtansine for HER2-positive advanced breast cancer. N Engl J Med 367 (19): 1783-91, 2012.23020162
Diéras V, Miles D, Verma S, et al.: Trastuzumab emtansine versus capecitabine plus lapatinib in patients with previously treated HER2-positive advanced breast cancer (EMILIA): a descriptive analysis of final overall survival results from a randomised, open-label, phase 3 trial. Lancet Oncol 18 (6): 732-742, 2017.28526536
Hurvitz SA, Dirix L, Kocsis J, et al.: Phase II randomized study of trastuzumab emtansine versus trastuzumab plus docetaxel in patients with human epidermal growth factor receptor 2-positive metastatic breast cancer. J Clin Oncol 31 (9): 1157-63, 2013.23382472
Krop IE, Kim SB, González-Martín A, et al.: Trastuzumab emtansine versus treatment of physician's choice for pretreated HER2-positive advanced breast cancer (TH3RESA): a randomised, open-label, phase 3 trial. Lancet Oncol 15 (7): 689-99, 2014.24793816
Krop IE, Kim SB, Martin AG, et al.: Trastuzumab emtansine versus treatment of physician's choice in patients with previously treated HER2-positive metastatic breast cancer (TH3RESA): final overall survival results from a randomised open-label phase 3 trial. Lancet Oncol 18 (6): 743-754, 2017.28526538
Perez EA, Barrios C, Eiermann W, et al.: Trastuzumab Emtansine With or Without Pertuzumab Versus Trastuzumab Plus Taxane for Human Epidermal Growth Factor Receptor 2-Positive, Advanced Breast Cancer: Primary Results From the Phase III MARIANNE Study. J Clin Oncol 35 (2): 141-148, 2017.28056202
Cortés J, Kim SB, Chung WP, et al.: Trastuzumab Deruxtecan versus Trastuzumab Emtansine for Breast Cancer. N Engl J Med 386 (12): 1143-1154, 2022.35320644
Rugo HS, Im SA, Cardoso F, et al.: Margetuximab Versus Trastuzumab in Patients With Previously Treated HER2-Positive Advanced Breast Cancer (SOPHIA): Final Overall Survival Results From a Randomized Phase 3 Trial. J Clin Oncol 41 (2): 198-205, 2023.36332179
Rugo HS, Im SA, Cardoso F, et al.: Efficacy of Margetuximab vs Trastuzumab in Patients With Pretreated ERBB2-Positive Advanced Breast Cancer: A Phase 3 Randomized Clinical Trial. JAMA Oncol 7 (4): 573-584, 2021.33480963
Murthy RK, Loi S, Okines A, et al.: Tucatinib, Trastuzumab, and Capecitabine for HER2-Positive Metastatic Breast Cancer. N Engl J Med 382 (7): 597-609, 2020.31825569
Saura C, Oliveira M, Feng YH, et al.: Neratinib Plus Capecitabine Versus Lapatinib Plus Capecitabine in HER2-Positive Metastatic Breast Cancer Previously Treated With ≥ 2 HER2-Directed Regimens: Phase III NALA Trial. J Clin Oncol 38 (27): 3138-3149, 2020.32678716
Geyer CE, Forster J, Lindquist D, et al.: Lapatinib plus capecitabine for HER2-positive advanced breast cancer. N Engl J Med 355 (26): 2733-43, 2006.17192538
André F, O'Regan R, Ozguroglu M, et al.: Everolimus for women with trastuzumab-resistant, HER2-positive, advanced breast cancer (BOLERO-3): a randomised, double-blind, placebo-controlled phase 3 trial. Lancet Oncol 15 (6): 580-91, 2014.24742739
Robson M, Im SA, Senkus E, et al.: Olaparib for Metastatic Breast Cancer in Patients with a Germline BRCA Mutation. N Engl J Med 377 (6): 523-533, 2017.28578601
Litton JK, Rugo HS, Ettl J, et al.: Talazoparib in Patients with Advanced Breast Cancer and a Germline BRCA Mutation. N Engl J Med 379 (8): 753-763, 2018.30110579
Ettl J, Quek RGW, Lee KH, et al.: Quality of life with talazoparib versus physician's choice of chemotherapy in patients with advanced breast cancer and germline BRCA1/2 mutation: patient-reported outcomes from the EMBRACA phase III trial. Ann Oncol 29 (9): 1939-1947, 2018.30124753
Barroso-Sousa R, Jain E, Cohen O, et al.: Prevalence and mutational determinants of high tumor mutation burden in breast cancer. Ann Oncol 31 (3): 387-394, 2020.32067680
Marabelle A, Fakih M, Lopez J, et al.: Association of tumour mutational burden with outcomes in patients with advanced solid tumours treated with pembrolizumab: prospective biomarker analysis of the multicohort, open-label, phase 2 KEYNOTE-158 study. Lancet Oncol 21 (10): 1353-1365, 2020.32919526
Alva AS, Mangat PK, Garrett-Mayer E, et al.: Pembrolizumab in Patients With Metastatic Breast Cancer With High Tumor Mutational Burden: Results From the Targeted Agent and Profiling Utilization Registry (TAPUR) Study. J Clin Oncol 39 (22): 2443-2451, 2021.33844595
Wilcken N, Dear R: Chemotherapy in metastatic breast cancer: A summary of all randomised trials reported 2000-2007. Eur J Cancer 44 (15): 2218-25, 2008.18722111
Ranson MR, Carmichael J, O'Byrne K, et al.: Treatment of advanced breast cancer with sterically stabilized liposomal doxorubicin: results of a multicenter phase II trial. J Clin Oncol 15 (10): 3185-91, 1997.9336354 97476103
Harris L, Batist G, Belt R, et al.: Liposome-encapsulated doxorubicin compared with conventional doxorubicin in a randomized multicenter trial as first-line therapy of metastatic breast carcinoma. Cancer 94 (1): 25-36, 2002.11815957 21673599
Keller AM, Mennel RG, Georgoulias VA, et al.: Randomized phase III trial of pegylated liposomal doxorubicin versus vinorelbine or mitomycin C plus vinblastine in women with taxane-refractory advanced breast cancer. J Clin Oncol 22 (19): 3893-901, 2004.15459210
Sparano JA, Makhson AN, Semiglazov VF, et al.: Pegylated liposomal doxorubicin plus docetaxel significantly improves time to progression without additive cardiotoxicity compared with docetaxel monotherapy in patients with advanced breast cancer previously treated with neoadjuvant-adjuvant anthracycline therapy: results from a randomized phase III study. J Clin Oncol 27 (27): 4522-9, 2009.19687336
Seidman AD, Berry D, Cirrincione C, et al.: Randomized phase III trial of weekly compared with every-3-weeks paclitaxel for metastatic breast cancer, with trastuzumab for all HER-2 overexpressors and random assignment to trastuzumab or not in HER-2 nonoverexpressors: final results of Cancer and Leukemia Group B protocol 9840. J Clin Oncol 26 (10): 1642-9, 2008.18375893
Gonzalez-Angulo AM, Hortobagyi GN: Optimal schedule of paclitaxel: weekly is better. J Clin Oncol 26 (10): 1585-7, 2008.18375889
Gradishar WJ, Tjulandin S, Davidson N, et al.: Phase III trial of nanoparticle albumin-bound paclitaxel compared with polyethylated castor oil-based paclitaxel in women with breast cancer. J Clin Oncol 23 (31): 7794-803, 2005.16172456
Ibrahim NK, Samuels B, Page R, et al.: Multicenter phase II trial of ABI-007, an albumin-bound paclitaxel, in women with metastatic breast cancer. J Clin Oncol 23 (25): 6019-26, 2005.16135470
Blum JL, Jones SE, Buzdar AU, et al.: Multicenter phase II study of capecitabine in paclitaxel-refractory metastatic breast cancer. J Clin Oncol 17 (2): 485-93, 1999.10080589 99178674
Blum JL, Dieras V, Lo Russo PM, et al.: Multicenter, Phase II study of capecitabine in taxane-pretreated metastatic breast carcinoma patients. Cancer 92 (7): 1759-68, 2001.11745247 21610189
Venturini M, Paridaens R, Rossner D, et al.: An open-label, multicenter study of outpatient capecitabine monotherapy in 631 patients with pretreated advanced breast cancer. Oncology 72 (1-2): 51-7, 2007.18004077
Degardin M, Bonneterre J, Hecquet B, et al.: Vinorelbine (navelbine) as a salvage treatment for advanced breast cancer. Ann Oncol 5 (5): 423-6, 1994.8075049 94355261
Carmichael J, Walling J: Advanced breast cancer: investigational role of gemcitabine. Eur J Cancer 33 (Suppl 1): S27-30, 1997.9166097 97308906
Vahdat LT, Pruitt B, Fabian CJ, et al.: Phase II study of eribulin mesylate, a halichondrin B analog, in patients with metastatic breast cancer previously treated with an anthracycline and a taxane. J Clin Oncol 27 (18): 2954-61, 2009.19349550
Cortes J, O'Shaughnessy J, Loesch D, et al.: Eribulin monotherapy versus treatment of physician's choice in patients with metastatic breast cancer (EMBRACE): a phase 3 open-label randomised study. Lancet 377 (9769): 914-23, 2011.21376385
Smith JW, Vukelja S, Rabe A, et al.: Phase II randomized trial of weekly and every-3-week ixabepilone in metastatic breast cancer patients. Breast Cancer Res Treat 142 (2): 381-8, 2013.24166282
Tranum BL, McDonald B, Thigpen T, et al.: Adriamycin combinations in advanced breast cancer. A Southwest Oncology Group Study. Cancer 49 (5): 835-9, 1982.7037152 82136590
Langley RE, Carmichael J, Jones AL, et al.: Phase III trial of epirubicin plus paclitaxel compared with epirubicin plus cyclophosphamide as first-line chemotherapy for metastatic breast cancer: United Kingdom National Cancer Research Institute trial AB01. J Clin Oncol 23 (33): 8322-30, 2005.16293863
Misset JL, Dieras V, Gruia G, et al.: Dose-finding study of docetaxel and doxorubicin in first-line treatment of patients with metastatic breast cancer. Ann Oncol 10 (5): 553-60, 1999.10416005 99344494
Buzdar AU, Kau SW, Smith TL, et al.: Ten-year results of FAC adjuvant chemotherapy trial in breast cancer. Am J Clin Oncol 12 (2): 123-8, 1989.2705401 89205454
Tormey DC, Gelman R, Band PR, et al.: Comparison of induction chemotherapies for metastatic breast cancer. An Eastern Cooperative Oncology Group Trial. Cancer 50 (7): 1235-44, 1982.7049347 82258833
Jassem J, Pieńkowski T, Płuzańska A, et al.: Doxorubicin and paclitaxel versus fluorouracil, doxorubicin, and cyclophosphamide as first-line therapy for women with metastatic breast cancer: final results of a randomized phase III multicenter trial. J Clin Oncol 19 (6): 1707-15, 2001.11251000 21150319
Biganzoli L, Cufer T, Bruning P, et al.: Doxorubicin and paclitaxel versus doxorubicin and cyclophosphamide as first-line chemotherapy in metastatic breast cancer: The European Organization for Research and Treatment of Cancer 10961 Multicenter Phase III Trial. J Clin Oncol 20 (14): 3114-21, 2002.12118025 22113133
O'Shaughnessy J, Miles D, Vukelja S, et al.: Superior survival with capecitabine plus docetaxel combination therapy in anthracycline-pretreated patients with advanced breast cancer: phase III trial results. J Clin Oncol 20 (12): 2812-23, 2002.12065558 22060839
Serin D, Verrill M, Jones A, et al.: Vinorelbine alternating oral and intravenous plus epirubicin in first-line therapy of metastatic breast cancer: results of a multicentre phase II study. Br J Cancer 92 (11): 1989-96, 2005.15928659
Thomas ES, Gomez HL, Li RK, et al.: Ixabepilone plus capecitabine for metastatic breast cancer progressing after anthracycline and taxane treatment. J Clin Oncol 25 (33): 5210-7, 2007.17968020
O'Shaughnessy J, Schwartzberg L, Danso MA, et al.: Phase III study of iniparib plus gemcitabine and carboplatin versus gemcitabine and carboplatin in patients with metastatic triple-negative breast cancer. J Clin Oncol 32 (34): 3840-7, 2014.25349301
Albain KS, Nag SM, Calderillo-Ruiz G, et al.: Gemcitabine plus Paclitaxel versus Paclitaxel monotherapy in patients with metastatic breast cancer and prior anthracycline treatment. J Clin Oncol 26 (24): 3950-7, 2008.18711184
Sledge GW, Neuberg D, Bernardo P, et al.: Phase III trial of doxorubicin, paclitaxel, and the combination of doxorubicin and paclitaxel as front-line chemotherapy for metastatic breast cancer: an intergroup trial (E1193). J Clin Oncol 21 (4): 588-92, 2003.12586793 22474347
Seidman AD: Sequential single-agent chemotherapy for metastatic breast cancer: therapeutic nihilism or realism? J Clin Oncol 21 (4): 577-9, 2003.12586789 22474343
Overmoyer B: Combination chemotherapy for metastatic breast cancer: reaching for the cure. J Clin Oncol 21 (4): 580-2, 2003.12586790 22474344
Honig SF: Hormonal therapy and chemotherapy. In: Harris JR, Morrow M, Lippman ME, et al., eds.: Diseases of the Breast. Lippincott-Raven Publishers. 1996, pp 669-734.
Perez EA: Current management of metastatic breast cancer. Semin Oncol 26 (4 Suppl 12): 1-10, 1999.10482189 99409915
Jones D, Ghersi D, Wilcken N: Addition of drug/s to a chemotherapy regimen for metastatic breast cancer. Cochrane Database Syst Rev 3: CD003368, 2006.16856005
Falkson G, Gelman RS, Pandya KJ, et al.: Eastern Cooperative Oncology Group randomized trials of observation versus maintenance therapy for patients with metastatic breast cancer in complete remission following induction treatment. J Clin Oncol 16 (5): 1669-76, 1998.9586877 98246289
Peters WP, Jones RB, Vrendenburgh J, et al.: A large, prospective, randomized trial of high-dose combination alkylating agents (CPB) with autologous cellular support (ABMS) as consolidation for patients with metastatic breast cancer achieving complete remission after intensive doxorubicin-based induction therapy (AFM). [Abstract] Proceedings of the American Society of Clinical Oncology 15: A-149, 121, 1996.
Muss HB, Case LD, Richards F, et al.: Interrupted versus continuous chemotherapy in patients with metastatic breast cancer. The Piedmont Oncology Association. N Engl J Med 325 (19): 1342-8, 1991.1922236 92018070
Falkson G, Gelman RS, Glick J, et al.: Metastatic breast cancer: higher versus low dose maintenance treatment when only a partial response or a no change status is obtained following doxorubicin induction treatment. An Eastern Cooperative Oncology Group study. Ann Oncol 3 (9): 768-70, 1992.1450067 93081355
Park YH, Jung KH, Im SA, et al.: Phase III, multicenter, randomized trial of maintenance chemotherapy versus observation in patients with metastatic breast cancer after achieving disease control with six cycles of gemcitabine plus paclitaxel as first-line chemotherapy: KCSG-BR07-02. J Clin Oncol 31 (14): 1732-9, 2013.23569309
Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823
Swain SM, Whaley FS, Gerber MC, et al.: Delayed administration of dexrazoxane provides cardioprotection for patients with advanced breast cancer treated with doxorubicin-containing therapy. J Clin Oncol 15 (4): 1333-40, 1997.9193324 97336577
Swain SM, Whaley FS, Gerber MC, et al.: Cardioprotection with dexrazoxane for doxorubicin-containing therapy in advanced breast cancer. J Clin Oncol 15 (4): 1318-32, 1997.9193323 97336576
Hensley ML, Schuchter LM, Lindley C, et al.: American Society of Clinical Oncology clinical practice guidelines for the use of chemotherapy and radiotherapy protectants. J Clin Oncol 17 (10): 3333-55, 1999.10506637 99438207
Marty M, Espié M, Llombart A, et al.: Multicenter randomized phase III study of the cardioprotective effect of dexrazoxane (Cardioxane) in advanced/metastatic breast cancer patients treated with anthracycline-based chemotherapy. Ann Oncol 17 (4): 614-22, 2006.16423847
Hortobagyi GN, Frye D, Buzdar AU, et al.: Decreased cardiac toxicity of doxorubicin administered by continuous intravenous infusion in combination chemotherapy for metastatic breast carcinoma. Cancer 63 (1): 37-45, 1989.2910423 89089506
Hensley ML, Hagerty KL, Kewalramani T, et al.: American Society of Clinical Oncology 2008 clinical practice guideline update: use of chemotherapy and radiation therapy protectants. J Clin Oncol 27 (1): 127-45, 2009.19018081
Venturini M, Michelotti A, Del Mastro L, et al.: Multicenter randomized controlled clinical trial to evaluate cardioprotection of dexrazoxane versus no cardioprotection in women receiving epirubicin chemotherapy for advanced breast cancer. J Clin Oncol 14 (12): 3112-20, 1996.8955656 97113816
Khan SA, Zhao F, Goldstein LJ, et al.: Early Local Therapy for the Primary Site in De Novo Stage IV Breast Cancer: Results of a Randomized Clinical Trial (EA2108). J Clin Oncol 40 (9): 978-987, 2022.34995128
Hartsell WF, Scott CB, Bruner DW, et al.: Randomized trial of short- versus long-course radiotherapy for palliation of painful bone metastases. J Natl Cancer Inst 97 (11): 798-804, 2005.15928300
Porter AT, McEwan AJ, Powe JE, et al.: Results of a randomized phase-III trial to evaluate the efficacy of strontium-89 adjuvant to local field external beam irradiation in the management of endocrine resistant metastatic prostate cancer. Int J Radiat Oncol Biol Phys 25 (5): 805-13, 1993.8478230 93239545
Quilty PM, Kirk D, Bolger JJ, et al.: A comparison of the palliative effects of strontium-89 and external beam radiotherapy in metastatic prostate cancer. Radiother Oncol 31 (1): 33-40, 1994.7518932 94316817
Hillner BE, Ingle JN, Chlebowski RT, et al.: American Society of Clinical Oncology 2003 update on the role of bisphosphonates and bone health issues in women with breast cancer. J Clin Oncol 21 (21): 4042-57, 2003.12963702
Paterson AH, Powles TJ, Kanis JA, et al.: Double-blind controlled trial of oral clodronate in patients with bone metastases from breast cancer. J Clin Oncol 11 (1): 59-65, 1993.8418243 93115782
Hortobagyi GN, Theriault RL, Lipton A, et al.: Long-term prevention of skeletal complications of metastatic breast cancer with pamidronate. Protocol 19 Aredia Breast Cancer Study Group. J Clin Oncol 16 (6): 2038-44, 1998.9626201 98289441
Powles T, Paterson A, McCloskey E, et al.: Reduction in bone relapse and improved survival with oral clodronate for adjuvant treatment of operable breast cancer [ISRCTN83688026]. Breast Cancer Res 8 (2): R13, 2006.16542503
Rosen LS, Gordon D, Kaminski M, et al.: Long-term efficacy and safety of zoledronic acid compared with pamidronate disodium in the treatment of skeletal complications in patients with advanced multiple myeloma or breast carcinoma: a randomized, double-blind, multicenter, comparative trial. Cancer 98 (8): 1735-44, 2003.14534891
Himelstein AL, Foster JC, Khatcheressian JL, et al.: Effect of Longer-Interval vs Standard Dosing of Zoledronic Acid on Skeletal Events in Patients With Bone Metastases: A Randomized Clinical Trial. JAMA 317 (1): 48-58, 2017.28030702
Lipton A, Fizazi K, Stopeck AT, et al.: Superiority of denosumab to zoledronic acid for prevention of skeletal-related events: a combined analysis of 3 pivotal, randomised, phase 3 trials. Eur J Cancer 48 (16): 3082-92, 2012.22975218

## Treatment of Ductal Carcinoma In Situ

### Introduction

Ductal carcinoma in situ (DCIS) is a noninvasive condition. DCIS can progress to invasive cancer, but estimates of the probability of this vary widely. Some reports include DCIS in breast cancer statistics. In 2025, DCIS is expected to account for about 16% of all newly diagnosed invasive plus noninvasive breast tumors in the United States.[1] For invasive and noninvasive tumors detected by screening, DCIS accounts for approximately 25% of all cases.

The frequency of a DCIS diagnosis has increased markedly in the United States since the use of screening mammography became widespread. Very few cases of DCIS present as a palpable mass, with more than 90% being diagnosed by mammography alone.[2]

DCIS comprises a heterogeneous group of histopathological lesions that have been classified into the following subtypes primarily because of architectural pattern:

- Micropapillary.
- Papillary.
- Solid.
- Cribriform.
- Comedo.

Comedo-type DCIS consists of cells that appear cytologically malignant, with the presence of high-grade nuclei, pleomorphism, and abundant central luminal necrosis. Comedo-type DCIS appears to be more aggressive, with a higher probability of associated invasive ductal carcinoma.[3]

### Treatment Options for DCIS

Treatment options for DCIS include:

1. Breast-conserving surgery or mastectomy plus radiation therapy with or without tamoxifen.
2. Total mastectomy with or without tamoxifen.

In the past, the customary treatment for DCIS was mastectomy.[4] The rationale for mastectomy included a 30% incidence of multicentric disease, a 40% prevalence of residual tumor at mastectomy after wide excision alone, and a 25% to 50% incidence of in-breast recurrence after limited surgery for palpable tumor, with 50% of those recurrences being invasive carcinoma.[4,5] The combined local and distant recurrence rate after mastectomy is 1% to 2%. No randomized comparisons of mastectomy versus breast-conserving surgery plus breast radiation therapy are available.

Because breast-conserving surgery combined with breast radiation therapy is successful for invasive carcinoma, this conservative approach was extended to DCIS. To determine whether breast-conserving surgery plus radiation therapy was a reasonable approach to the management of DCIS, the National Surgical Adjuvant Breast and Bowel Project (NSABP) and the European Organisation for Research and Treatment of Cancer (EORTC) have each completed prospective randomized trials in which women with localized DCIS and negative surgical margins after excisional biopsy were randomly assigned to receive either breast radiation therapy (50 Gy) or no further therapy.[6-9] To date, no randomized controlled trial has found a survival benefit for DCIS treated with either adjuvant radiation therapy or adjuvant hormonal therapy, although both have been found to reduce recurrence risk.

Evidence (breast-conserving surgery plus radiation therapy to the breast):

1. Of the 818 women enrolled in the NSABP-B-17 trial, 80% were diagnosed by mammography, and 70% of the patients' lesions were 1 cm or smaller. Results were reported at the 12-year actuarial follow-up interval.[7]; [9][Level of evidence B1]
  - The overall rate of in-breast tumor recurrence was reduced from 31.7% to 15.7% when radiation therapy was delivered (P < .005).
  - Radiation therapy reduced the occurrence of invasive cancer from 16.8% to 7.7% (P = .001) and recurrent DCIS from 14.6% to 8.0% (P = .001).
  - Nine pathological features were evaluated for their ability to predict for in-breast recurrence, but only comedo necrosis was a significant predictor for recurrence.
2. Similarly, of the 1,010 patients enrolled in the EORTC-10853 trial, mammography detected lesions in 71% of the women. Results were reported at a median follow-up of 10.5 years.[9][Level of evidence B1]
  - The overall rate of in-breast tumor recurrence was reduced from 26% to 15% (P < .001), with a similarly effective reduction of invasive recurrence rates (13% to 8%, P = .065) and noninvasive recurrence rates (14% to 7%, P = .001).
  - In this analysis, parameters associated with an increased risk of in-breast recurrence included age 40 years or younger, palpable disease, intermediate or poorly differentiated DCIS, cribriform or solid growth pattern, and indeterminate margins. Elsewhere, margins of less than 1 mm have been associated with an unacceptable local recurrence rate, even with radiation therapy.[10]
  In both studies, the effect of radiation therapy was consistent across all assessed risk factors.
3. The benefit of administering radiation therapy has been confirmed in a systematic review of four randomized trials (hazard ratio [HR], 0.49; 95% confidence interval [CI], 0.41–0.58; P < .00001). In this study, the number needed to treat with radiation therapy was nine women to prevent one ipsilateral breast recurrence.[11]
4. A large national clinical trial by the Radiation Therapy Oncology Group (RTOG-9804 (https://www.cancer.gov/clinicaltrials/NCT00003857) [NCT00003857]) comparing breast-conserving surgery and tamoxifen with or without radiation therapy was closed because of poor accrual (636 of planned 1,790 patients accrued). Patients with good-risk DCIS (defined as mammographically detected low- or intermediate-grade DCIS, measuring <2.5 cm with margins of ≥3 mm) were enrolled.[12]
  - The 15-year cumulative incidence of in-breast recurrence was 7.1% (95% CI, 4.0%–11.5%) with radiation therapy versus 15.1% (95% CI, 10.8%–20.2%) with observation (HR, 0.36; 95% CI, 0.20–0.66; P = .0007). On multivariable analysis, only radiation therapy (HR, 0.34; 95% CI, 0.19–0.64; P = .0007) and tamoxifen use (HR, 0.45; 95% CI, 0.25–0.78; P = .0047) were associated with reduced in-breast recurrence.[13]

The results of the NSABP-B-17 and EORTC-10853 trials plus two others were included in a meta-analysis that demonstrated reductions in all ipsilateral breast events (HR, 0.49; 95% CI, 0.41–0.58; P < .00001), ipsilateral invasive recurrence (HR, 0.50; 95% CI, 0.32–0.76; P = .001), and ipsilateral DCIS recurrence (HR, 0.61; 95% CI, 0.39–0.95; P = .03).[14][Level of evidence B1] However, after 10 years of follow-up, there was no significant effect on breast cancer mortality, mortality from causes other than breast cancer, or all-cause mortality.[11]

To identify a favorable group of patients for whom postoperative radiation therapy could be omitted, several pathological staging systems have been developed and tested retrospectively, but consensus recommendations have not been achieved.[15-18]

The Van Nuys Prognostic Index is one pathological staging system that combines three predictors of local recurrence (i.e., tumor size, margin width, and pathological classification). It was used to retrospectively analyze 333 patients treated with either excision alone or excision and radiation therapy.[18] Using this prognostic index, patients with favorable lesions who received surgical excision alone had a low recurrence rate (i.e., 2%, with a median follow-up of 79 months). A subsequent analysis of these data was performed to determine the influence of margin width on local control.[19] Patients whose excised lesions had margin widths of 10 mm or more in every direction had an extremely low probability of local recurrence with surgery alone (4%, with a mean follow-up of 8 years).

Both reviews are retrospective, noncontrolled, and subject to substantial selection bias. In contrast, the prospective NSABP trial did not identify any subset of patients who did not benefit from the addition of radiation therapy to breast-conserving surgery in the management of DCIS.[3,6,14,20]

To determine whether tamoxifen adds to the efficacy of local therapy in the management of DCIS, the NSABP performed a double-blind prospective trial (NSABP-B-24).

Evidence (adjuvant endocrine therapy):

1. In NSABP-B-24, 1,804 women were randomly assigned to receive breast-conserving surgery, radiation therapy (50 Gy), and placebo or breast-conserving surgery, radiation therapy, and tamoxifen (20 mg qd for 5 years).[21] Positive or unknown surgical margins were present in 23% of patients. Approximately 80% of the lesions measured 1 cm or smaller, and more than 80% were detected mammographically. Breast cancer events were defined as the presence of new ipsilateral disease, contralateral disease, or metastases.
  - Women in the tamoxifen group had fewer breast cancer events at 5 years than did those treated with a placebo (8.2% vs. 13.4%; P = .009).[21][Level of evidence B1]
  - With tamoxifen, ipsilateral invasive breast cancer decreased from 4.2% to 2.1% at 5 years (P = .03).
  - Tamoxifen also decreased the incidence of contralateral breast neoplasms (invasive and noninvasive) from 0.8% per year to 0.4% per year (P = .01).
  - The benefit of tamoxifen extended to patients with positive or uncertain margins.[22] For more information, see Breast Cancer Prevention.
  - No survival advantage was demonstrated for the use of tamoxifen.
2. In the NSABP-B35 double-blind study, 3,104 postmenopausal women with DCIS who were treated with breast-conserving surgery were randomly assigned to receive either adjuvant tamoxifen or anastrozole, in addition to adjuvant radiation therapy.
  - The use of anastrozole was associated with significantly fewer breast cancer events (HR, 0.73; P = .023) but no improvement in survival.[23][Level of evidence B1]
3. The Second International Breast Cancer Intervention Study (IBIS II DCIS (https://www.cancer.gov/clinicaltrials/NCT00078832) [NCT00078832]) enrolled 2,980 postmenopausal women in a double-blind comparison of tamoxifen with anastrozole as adjuvant therapy. All of the women had breast-conserving surgery, and 71% of them had radiation therapy.[24]
  - No difference in the rate of breast cancer recurrence in favor of anastrozole was found (HR, 0.89; 95% CI, 0.64–1.23; P = .49), and there was no difference in survival.

The decision to prescribe endocrine therapy after a diagnosis of DCIS often involves a discussion with the patient about the potential benefits and side effects of each agent.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Siegel R, Ward E, Brawley O, et al.: Cancer statistics, 2011: the impact of eliminating socioeconomic and racial disparities on premature cancer deaths. CA Cancer J Clin 61 (4): 212-36, 2011 Jul-Aug.21685461
Fisher ER, Dignam J, Tan-Chiu E, et al.: Pathologic findings from the National Surgical Adjuvant Breast Project (NSABP) eight-year update of Protocol B-17: intraductal carcinoma. Cancer 86 (3): 429-38, 1999.10430251 99357320
Fonseca R, Hartmann LC, Petersen IA, et al.: Ductal carcinoma in situ of the breast. Ann Intern Med 127 (11): 1013-22, 1997.9412283 98031971
Lagios MD, Westdahl PR, Margolin FR, et al.: Duct carcinoma in situ. Relationship of extent of noninvasive disease to the frequency of occult invasion, multicentricity, lymph node metastases, and short-term treatment failures. Cancer 50 (7): 1309-14, 1982.6286091 82258846
Fisher B, Dignam J, Wolmark N, et al.: Lumpectomy and radiation therapy for the treatment of intraductal breast cancer: findings from National Surgical Adjuvant Breast and Bowel Project B-17. J Clin Oncol 16 (2): 441-52, 1998.9469327 98129229
Fisher B, Land S, Mamounas E, et al.: Prevention of invasive breast cancer in women with ductal carcinoma in situ: an update of the national surgical adjuvant breast and bowel project experience. Semin Oncol 28 (4): 400-18, 2001.11498833 21390070
Julien JP, Bijker N, Fentiman IS, et al.: Radiotherapy in breast-conserving treatment for ductal carcinoma in situ: first results of the EORTC randomised phase III trial 10853. EORTC Breast Cancer Cooperative Group and EORTC Radiotherapy Group. Lancet 355 (9203): 528-33, 2000.10683002 20145207
Bijker N, Meijnen P, Peterse JL, et al.: Breast-conserving treatment with or without radiotherapy in ductal carcinoma-in-situ: ten-year results of European Organisation for Research and Treatment of Cancer randomized phase III trial 10853--a study by the EORTC Breast Cancer Cooperative Group and EORTC Radiotherapy Group. J Clin Oncol 24 (21): 3381-7, 2006.16801628
Chan KC, Knox WF, Sinha G, et al.: Extent of excision margin width required in breast conserving surgery for ductal carcinoma in situ. Cancer 91 (1): 9-16, 2001.11148554 21066990
Correa C, McGale P, Taylor C, et al.: Overview of the randomized trials of radiotherapy in ductal carcinoma in situ of the breast. J Natl Cancer Inst Monogr 2010 (41): 162-77, 2010.20956824
McCormick B, Winter K, Hudis C, et al.: RTOG 9804: a prospective randomized trial for good-risk ductal carcinoma in situ comparing radiotherapy with observation. J Clin Oncol 33 (7): 709-15, 2015.25605856
McCormick B, Winter KA, Woodward W, et al.: Randomized Phase III Trial Evaluating Radiation Following Surgical Excision for Good-Risk Ductal Carcinoma In Situ: Long-Term Report From NRG Oncology/RTOG 9804. J Clin Oncol 39 (32): 3574-3582, 2021.34406870
Goodwin A, Parker S, Ghersi D, et al.: Post-operative radiotherapy for ductal carcinoma in situ of the breast. Cochrane Database Syst Rev 11: CD000563, 2013.24259251
Page DL, Lagios MD: Pathologic analysis of the National Surgical Adjuvant Breast Project (NSABP) B-17 Trial. Unanswered questions remaining unanswered considering current concepts of ductal carcinoma in situ. Cancer 75 (6): 1219-22; discussion 1223-7, 1995.7882273 95188102
Fisher ER, Costantino J, Fisher B, et al.: Response - blunting the counterpoint. Cancer 75 (6): 1223-1227, 1995.
Holland R, Peterse JL, Millis RR, et al.: Ductal carcinoma in situ: a proposal for a new classification. Semin Diagn Pathol 11 (3): 167-80, 1994.7831528 95132894
Silverstein MJ, Lagios MD, Craig PH, et al.: A prognostic index for ductal carcinoma in situ of the breast. Cancer 77 (11): 2267-74, 1996.8635094 96224892
Silverstein MJ, Lagios MD, Groshen S, et al.: The influence of margin width on local control of ductal carcinoma in situ of the breast. N Engl J Med 340 (19): 1455-61, 1999.10320383 99240025
Goodwin A, Parker S, Ghersi D, et al.: Post-operative radiotherapy for ductal carcinoma in situ of the breast--a systematic review of the randomised trials. Breast 18 (3): 143-9, 2009.19447038
Fisher B, Dignam J, Wolmark N, et al.: Tamoxifen in treatment of intraductal breast cancer: National Surgical Adjuvant Breast and Bowel Project B-24 randomised controlled trial. Lancet 353 (9169): 1993-2000, 1999.10376613 99303106
Houghton J, George WD, Cuzick J, et al.: Radiotherapy and tamoxifen in women with completely excised ductal carcinoma in situ of the breast in the UK, Australia, and New Zealand: randomised controlled trial. Lancet 362 (9378): 95-102, 2003.12867108
Margolese RG, Cecchini RS, Julian TB, et al.: Anastrozole versus tamoxifen in postmenopausal women with ductal carcinoma in situ undergoing lumpectomy plus radiotherapy (NSABP B-35): a randomised, double-blind, phase 3 clinical trial. Lancet 387 (10021): 849-56, 2016.26686957
Forbes JF, Sestak I, Howell A, et al.: Anastrozole versus tamoxifen for the prevention of locoregional and contralateral breast cancer in postmenopausal women with locally excised ductal carcinoma in situ (IBIS-II DCIS): a double-blind, randomised controlled trial. Lancet 387 (10021): 866-73, 2016.26686313

## Latest Updates to This Summary (04/25/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Surgical Treatment for Breast Cancer

Added text to state that, although sentinel lymph node (SLN) biopsy has been the standard for the axillary staging of patients with invasive breast cancer and a clinically negative axilla, two randomized controlled trials have identified populations for which SLN biopsy could be omitted. The SOUND trial randomly assigned 1,493 women with invasive breast cancer to undergo SLN biopsy or no axillary surgery. Patients were of any age, had tumors smaller than 2 cm, had negative preoperative axillary ultrasonography, and planned to receive breast-conserving surgery and adjuvant radiation therapy (cited Gentilini et al. as reference 34 and level of evidence A1). The INSEMA trial randomly assigned 5,502 women with clinically node-negative invasive breast cancer to undergo no axillary surgery or SLN biopsy. Tumors had to be smaller than 5 cm, and most patients had T1 disease and estrogen receptor–positive tumors. Patients were scheduled to undergo breast-conserving surgery and whole-breast radiation therapy (cited Reimer et al. as reference 35 and level of evidence A1).

Systemic Therapy for Stages I, II, and III Breast Cancer

Added text about an open-label trial in Japan that included 1,697 patients who had received either (1) 5 years of anastrozole or (2) 2 to 3 years of tamoxifen, followed by 2 to 3 years of anastrozole. Patients were randomly assigned to either discontinue anastrozole or continue it for 5 years (cited Iwase et al. as reference 88 and level of evidence B1).

Revised text about a trial that examined the effect of adding abemaciclib to standard endocrine therapy in women with HER2-negative hormone receptor–positive breast cancer who were at high risk of recurrence. Similar results were found in a prespecified subgroup analysis of patients who had received neoadjuvant chemotherapy and had residual disease after surgery (cited Martin et al. as reference 91).

Added Immunotherapy as a new subsection in the Postoperative therapy for triple-negative breast cancer section.

Revised text about the results of a single-arm trial that evaluated paclitaxel and trastuzumab in 410 women with node-negative, small, HER2-positive tumors (cited Tolaney et al. as reference 145).

Treatment of Metastatic Breast Cancer

Revised text about the results of a randomized, double-blind, phase III trial that evaluated first-line abemaciclib or placebo plus a nonsteroidal aromatase inhibitor in 493 postmenopausal women with HER2-negative hormone receptor–positive, advanced breast cancer (cited Goetz et al. as reference 20 and level of evidence B1).

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult breast cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Breast Cancer Treatment are:

- Fumiko Chino, MD (MD Anderson Cancer Center)
- Tarek Hijal, MD (McGill University Health Centre)
- Joseph L. Pater, MD (NCIC-Clinical Trials Group)
- Carol Tweed, MD (Maryland Oncology Hematology)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Breast Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/breast/hp/breast-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389406]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).